# Late Effects of Treatment for Childhood Cancer (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the late effects of treatment for childhood cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Late Effects of Treatment for Childhood Cancer

During the past five decades, dramatic progress has been made in the development of curative therapies for pediatric malignancies. More than 80% of children with cancer who have access to contemporary therapies are expected to survive into adulthood.[1] The therapies responsible for this survival can also produce adverse, long-term, health-related outcomes, referred to as late effects, which appear months to years after completion of cancer treatment.

Many approaches have been used to study the very long-term morbidity associated with childhood cancer and its contribution to early mortality. These initiatives have used a spectrum of resources, including data from the following:

- Population-based registries.[2,3]
- Self-reported outcomes (provided through large-scale cohort studies).[4,5]
- Medical assessments.[6-8]

High-quality data is needed to establish the occurrence of and risk profiles for late cancer treatment–related toxicity. The highest quality data typically comes from studies that report outcomes in survivors who have undergone medical assessments that provide well-characterized clinical statuses, treatment exposures, and specific late effects. Regardless of study methodology, it is important to consider selection and participation bias of the cohort studies in the context of the findings.

### Prevalence of Late Effects in Childhood Cancer Survivors

Late effects are common in adults who have survived childhood cancer. Their prevalence increases as time from cancer diagnosis elapses. Multi-institutional and population-based studies have shown excess risk of hospital-related morbidity among childhood and young adult cancer survivors compared with age- and sex-matched controls, with some evidence that this risk is disproportionately high among survivors of racial and ethnic minority populations.[3,9-13]

Among adults who were treated for cancer during childhood, late effects contribute to a high burden of morbidity. Research has shown the following:[4,7,14-18]

- 60% to more than 90% of survivors develop one or more chronic health conditions.
- 20% to 80% of survivors experience severe or life-threatening complications during adulthood.
- Morbidity accumulation is accelerated in young adult survivors of childhood cancer, compared with that of siblings and the general population. Accumulation of chronic diseases predicts risk of early mortality.[19]

The St. Jude Life (SJLIFE) cohort study aimed to describe the cumulative burden of cancer therapy using the cumulative burden metric, which incorporates multiple health conditions and recurrent events into a single metric that takes into account competing risks. By age 50 years, survivors in this cohort experienced an average of 17.1 chronic health conditions, 4.7 of which were severe/disabling, life threatening, or fatal.[16] This finding contrasts with the cumulative burden in matched community controls, who experienced 9.2 chronic health conditions, 2.3 of which were severe/disabling, life threatening, or fatal (see Figure 1).[16]

Figure 1. Figure shows distribution of cumulative burden by age among childhood cancer survivors of specific pediatric cancer subtypes and community controls participating in the SJLIFE cohort study. The cumulative burden at age 30 years and rate of cumulative burden growth is variable across cancer subtypes and organ systems. Reprinted from The Lancet (https://www.sciencedirect.com/journal/the-lancet), Volume 390, Issue 10112, Bhakta N, Liu Q, Ness KK, Baassiri M, Eissa H, Yeo F, Chemaitilly W, Ehrhardt MJ, Bass J, Bishop MW, Shelton K, Lu L, Huang S, Li Z, Caron E, Lanctot J, Howell C, Folse T, Joshi V, Green DM, Mulrooney DA, Armstrong GT, Krull KR, Brinkman TM, Khan RB, Srivastava DK, Hudson MM, Yasui Y, Robison LL, The cumulative burden of surviving childhood cancer: an initial report from the St Jude Lifetime Cohort Study (SJLIFE), Pages 2569–2582, Copyright (2017), with permission from Elsevier.

Charts showing distribution of cumulative burden by age among childhood cancer survivors of specific pediatric cancer subtypes and community controls participating in St. Jude Lifetime Cohort Study.

SJLIFE cohort study investigators compared the cumulative burden of chronic health conditions among 4,612 adolescent and young adult survivors at the ages of 18 years (the time of transition from pediatric to adult health care systems) and 26 years (the time of transition from family to individual health insurance plans) with that of 625 controls.[20]

- Survivors at the age of 18 years experienced an average of 22.3 disabling conditions per 100 individuals versus 3.5 in controls, and 128.7 lower-severity conditions (at risk of progressing to higher-grade disabling conditions) versus 12.4 in controls.
- Survivors at the age of 26 years experienced an average of 40.3 disabling conditions per 100 individuals versus 5.7 in controls, and 240.5 lower-severity conditions versus 51.3 in controls.
- The cumulative burden of disabling, disease-specific conditions at the ages of 18 and 26 years was most notable for survivors of bone tumors (musculoskeletal: 99.9 and 121.70, respectively), soft tissue sarcomas (musculoskeletal: 49.5 and 54.1, respectively), and central nervous system (CNS) tumors (neurological: 24.7 and 36.8, respectively).
- The cumulative burden of lower-severity conditions (potentially amenable to intervention) at the ages of 18 and 26 years was most notable for neurological conditions across most cancer subgroups, with the highest cumulative burden in CNS tumor survivors (95.2 and 162.3, respectively).
- These findings highlight the importance of optimizing access to health care and health insurance as survivors age and can no longer participate in pediatric health care systems.

The variability in prevalence is related to differences in the following:

- Age and follow-up time of the cohorts studied.
- Methods and consistency of assessment (e.g., self-reported vs. risk-based medical evaluations).
- Treatment intensity and treatment era.

Childhood Cancer Survivor Study (https://www.cancer.gov/types/childhood-cancers/ccss) (CCSS) investigators demonstrated that the elevated risk of morbidity and mortality among aging survivors in the cohort increases beyond the fourth decade of life. By age 50 years, the cumulative incidence of a self-reported severe, disabling, life-threatening, or fatal health condition was 53.6% among survivors, compared with 19.8% among a sibling control group. Among survivors who reached age 35 years without a previous severe, disabling, life-threatening, or fatal health condition, 25.9% experienced a new grade 3 to grade 5 health condition within 10 years, compared with 6.0% of healthy siblings.[4]

The presence of serious, disabling, and life-threatening chronic health conditions adversely affects the health status of aging survivors. The greatest impact is on functional impairment and activity limitations. Predictably, chronic health conditions have been reported to contribute to a higher prevalence of emotional distress symptoms in adult survivors than in population controls.[21] Female survivors demonstrate a steeper trajectory of age-dependent decline in health status than do male survivors.[22] The even-higher prevalence of late effects among cohorts evaluated by clinical assessments is related to the subclinical and undiagnosed conditions detected by screening and surveillance measures.[7]

CCSS investigators also evaluated the impact of race and ethnicity on late outcomes. The study compared late mortality, subsequent neoplasms, and chronic health conditions in Hispanic (n = 750) and non-Hispanic Black (n = 694) participants with those in non-Hispanic White participants (n = 12,397).[23] The following results were observed:

- Cancer treatment did not account for disparities in mortality, chronic health conditions, or subsequent neoplasms observed among the groups.
- Differences in socioeconomic status and cardiovascular risk factors affected risk. All-cause mortality was higher among non-Hispanic Black participants than among other groups, but this difference disappeared after adjustment for socioeconomic status.
- Risk of developing diabetes was elevated among racial and ethnic minority groups even after adjustment for socioeconomic and obesity status.
- Non-Hispanic Black patients had a higher likelihood of reporting cardiac conditions, but this risk diminished after adjusting for cardiovascular risk factors.
- Nonmelanoma skin cancer was not reported by non-Hispanic Black participants, a finding that has been replicated by other studies.[24] Hispanic participants had a lower risk of nonmelanoma skin cancer than non-Hispanic White participants.

Recognition of late effects, concurrent with advances in cancer biology, radiological sciences, and supportive care, has resulted in a change in the prevalence and spectrum of treatment effects. In an effort to reduce and prevent late effects, contemporary therapy for most pediatric malignancies has evolved to a risk-adapted approach that is assigned on the basis of a variety of clinical, biological, and sometimes genetic factors.

The CCSS reported that with decreased cumulative dose and frequency of therapeutic radiation from 1970 to 1999, survivors have experienced a significant decrease in risk of subsequent neoplasms.[25]

- With the exception of survivors requiring intensive multimodality therapy for refractory/relapsed malignancies, life-threatening treatment effects are relatively uncommon after contemporary therapy in early follow-up (up to 10 years after diagnosis).
- However, survivors still frequently experience life-altering morbidity related to effects of cancer treatment on endocrine, reproductive, musculoskeletal, and neurological function.

A CCSS investigation examined temporal patterns in the cumulative incidence of severe to fatal chronic health conditions among survivors treated from 1970 to 1999.[26]

- The 20-year cumulative incidence of at least one grade 3 to 5 chronic condition decreased significantly, from 33.2% for survivors diagnosed between 1970 and 1979, to 29.3% for those diagnosed between 1980 and 1989, to 27.5% for those diagnosed between 1990 and 1999, compared with a 4.6% incidence in a sibling cohort.
- The overall decrease in incidence of chronic conditions across the three treatment decades was, in part, because of a substantial reduction of endocrinopathies, subsequent malignant neoplasms (SMNs), musculoskeletal conditions, and gastrointestinal conditions, whereas the cumulative incidence of hearing loss increased during this time.
- Declines in morbidity were not uniform across the diagnosis groups or condition types because of differences in treatment and survival patterns over time. For more information, see Figure 2.
- Despite declines in chronic health conditions over time, self-reported health status has not improved in more recent treatment eras. This finding may be because of the survival of children with higher-risk disease who would have previously died of cancer, or an enhanced awareness of and surveillance for late effects among more recently treated survivors.[27]

Figure 2. Cumulative incidence of grade 3–5 chronic health conditions in 5-year survivors of childhood cancer by diagnosis decade and siblings. (A) Cumulative incidence of a first grade 3–5 condition. (B) Cumulative incidence of two or more grade 3–5 conditions. The shaded area represents the 95% confidence interval (CI). The number of participants at risk (number censored) at each 5-year interval post-diagnosis is listed below the x-axis. The number censored does not include those who experienced a competing risk event (death from a cause other than a grade 5 chronic condition). Reprinted from The Lancet Oncology (https://www.sciencedirect.com/journal/the-lancet-oncology), Volume 19, Issue 12, Todd M Gibson, Sogol Mostoufi-Moab, Kayla L Stratton, Wendy M Leisenring, Dana Barnea, Eric J Chow, Sarah S Donaldson, Rebecca M Howell, Melissa M Hudson, Anita Mahajan, Paul C Nathan, Kirsten K Ness, Charles A Sklar, Emily S Tonorezos, Christopher B Weldon, Elizabeth M Wells, Yutaka Yasui, Gregory T Armstrong, Leslie L Robinson, Kevin C Oeffinger, Temporal patterns in the risk of chronic health conditions in survivors of childhood cancer diagnosed 1970–99: a report from the Childhood Cancer Survivor Study cohort. Pages 1590-1601, Copyright (2018), with permission from Elsevier.

Graphs showing the cumulative incidence of grade 3–5 chronic health conditions in 5-year survivors of childhood cancer by diagnosis decade and siblings.

### Mortality

Late effects also contribute to an excess risk of premature death among long-term survivors of childhood cancer, as observed in the following studies:

- Several studies of large cohorts of survivors have reported early mortality among individuals treated for childhood cancer, compared with age- and sex-matched general population controls. Relapsed/refractory primary cancer remains the most frequent cause of death, followed by excess cause-specific mortality from subsequent primary cancers, and cardiac and pulmonary toxicity.[28-33]
- A CCSS study evaluated specific health-related causes of late mortality and excess deaths, compared with the general U.S. population to identify targets to reduce future risk.[33]
  - At a median follow-up of 29 years from diagnosis, the 40-year cumulative all-cause mortality rate was 23.3%, with 51.2% of deaths attributed to health-related causes.
  - Survivors who were 40 or more years from diagnosis experienced 131 excess health-related deaths per 10,000 person-years (95% confidence interval [CI], 111–163). Excess deaths were most commonly related to cancer (absolute excess risk per 10,000 person-years, 54; 95% CI, 41–68), heart disease (27; 18–38), and cerebrovascular disease (10; 5–17).
  - Healthy lifestyle (assessed by smoking status, alcohol consumption, physical activity, body mass index, and absence of hypertension and diabetes) were each associated with a 20% to 30% reduction in health-related mortality, independent of other factors.
- An analysis of the CCSS and Surveillance, Epidemiology, and End Results (SEER) Program data evaluated conditional survival. The study demonstrated a subsequent 5-year survival rate of 92% or higher among most diagnoses at 5 years, 10 years, 15 years, and 20 years. Among those who had survived at least 5 years from diagnosis, the probability of all-cause mortality in the next 10 years was 8.8% in the CCSS and 10.6% in the SEER study, with neoplasms accounting for cause of death in approximately 75% of survivors.[34]

Despite high premature morbidity rates, overall mortality has decreased over time.[28,30,31,35,36]

CCSS investigators evaluated all-cause and health-related late mortality (including late effects of cancer therapy), SMNs, chronic health conditions, and neurocognitive outcomes among 6,148 survivors of childhood acute lymphoblastic leukemia (median age, 27.9 years; range, 5.9–61.9 years) diagnosed between 1970 and 1999.[37]

- Overall, the 20-year all-cause late mortality rate was 6.6%.
- Compared with participants who were treated in the 1970s, patients who were treated with risk-stratified regimens in the 1990s experienced lower health-related late mortality (rate ratio: 1990s standard risk, 0.2; 1990s high risk, 0.3), which was comparable to the U.S. population (standardized mortality ratio [SMR]: 1990s standard risk, 1.3; 1990s high risk, 1.7).

The risk of late mortality and serious chronic health conditions have decreased over time among survivors of acute myeloid leukemia (AML). CCSS investigators evaluated the long-term morbidity, mortality, and health status of more than 800 5-year survivors of childhood AML based on treatment and treatment era. Survivors were compared by treatment group (hematopoietic stem cell transplant [HSCT]); chemotherapy with cranial radiation [CRT]; chemotherapy only) and decade of diagnosis.[38]

- Among 856 survivors, the 20-year late mortality cumulative incidence was highest after HSCT (13.9%; chemotherapy with CRT, 7.6%; chemotherapy only, 5.1%).
- Mortality cumulative incidence decreased for survivors of HSCT diagnosed in the 1990s (8.5%) compared with the 1970s (38.9%), as did standardized mortality rates.
- Self-reported health status was good to excellent for 88.2% of childhood AML survivors, regardless of treatment.
- Most survivors did not experience any grade 3 to 5 chronic health conditions after 20 years (HSCT, 45.8%; chemotherapy with CRT, 23.7%; chemotherapy only, 27.0%).
- A temporal reduction in chronic health conditions cumulative incidence was seen after HSCT (1970s, 76.1%; 1990s, 38.3%; P = .02), mirroring a reduction in total-body irradiation use.

Population-based data from a state cancer registry was used to evaluate differences in survival and long-term outcomes by race and ethnicity among 4,222 children diagnosed with cancer between 1987 and 2012.[12]

- Compared with non-Hispanic White children, hospitalization was 70% (hazard ratio [HR], 1.7) more common 5 or more years after diagnosis for American Indian and Alaskan Native children and 50% (HR, 1.5) more common for Black children.
- Among survivors at 5 or more years from diagnosis, 2.3-fold to 3.6-fold statistically significant relative increases were observed for hospitalizations for specific conditions for American Indian and Alaskan Native children (HR, 2.3 for infection-related conditions; HR, 3.0 for hematologic-related conditions; HR, 2.6 for digestive-related conditions). The greatest increases were noted for mental health–related conditions (HR, 3.6), a pattern also noted for Black children (HR, 2.5).

An SJLIFE cohort study explored associations between modifiable chronic health conditions and late mortality within the context of social determinants of health.[39]

- Among 9,440 5-year childhood cancer survivors included in the analysis (median age at last follow-up, 27.5 years; median follow-up, 18.8 years), all-cause mortality (SMR, 7.6; 95% CI, 7.2–8.1) and health-related late mortality (SMR, 7.6; 95% CI, 7.0–8.2) was significantly higher than expected for U.S. mortality rates.
- Among 3,407 adult participants who completed an on-campus assessment (median age at assessment, 35.4 years; median follow-up, 27.3 years), significant increases in late all-cause and health-related deaths were associated with the number of modifiable chronic health conditions, living in a U.S. census block associated with a high area deprivation index, and frailty.
- Specific associations for excess health-related mortality included: one grade 2 modifiable chronic health condition (rate ratio [RR], 2.2; 95% CI, 1.1–4.4), two grade 2 modifiable chronic health conditions (RR, 2.5; 95% CI, 1.2–5.2), three grade 2 modifiable chronic health conditions (RR, 4.0; 95% CI, 1.9–8.4), area deprivation index in 51st to 80th percentile (RR, 9.2; 95% CI, 1.2–69.7), area deprivation index in 81st to 100th percentile (RR, 16.2; 95% CI, 2.1–123.7), and frailty (RR, 2.3; 95% CI, 1.2–4.1).

The CCSS and an SJLIFE cohort study investigated the contribution of cancer-predisposing variants to the risk of SMN-related late mortality (5 years or more after diagnosis).[40]

- Among 12,469 participants (6,172 male and 6,297 female), including 4,402 from the SJLIFE cohort (median follow-up time since collection of first biospecimen, 7.4 years) and 8,067 from the CCSS cohort (median follow-up time since collection of the first biospecimen, 12.6 years), 641 (5.1%) carried cancer-predisposing variants.
- Cancer-predisposing variants were significantly associated with an increased severity of SMNs (common terminology criteria for adverse events grade ≥4 vs. grade <4: odds ratio [OR], 2.15; 95% CI, 1.18–4.19).
- SMN-related deaths occurred in 263 participants (2.1%), and other-cause deaths occurred in 426 survivors (3.4%).
- At 10 years after the first biospecimen collection, the cumulative SMN-related mortality rate in carriers of cancer-predisposing variants was 3.7% (95% CI, 1.2%–8.5%) in SJLIFE and 6.9% (4.1%–10.7%) in CCSS. In comparison, the cumulative SMN-related mortality rate in noncarriers was 1.5% (1.0%–2.1%) in SJLIFE and 2.1% (1.7%–2.5%) in CCSS.
- Carrying a cancer-predisposing variant was associated with an increased risk of SMN-related mortality (SJLIFE: HR, 3.40; 95% CI, 1.37–8.43; CCSS: HR, 3.58; 95% CI, 2.27–5.63).

#### Survivors of adolescent and young adult (AYA) cancers

Little information is available on late mortality among survivors of AYA cancer.[41-44]

- Using SEER data, conditional relative survival up to 25 years after diagnosis was studied in a cohort of AYA patients (N = 205,954) diagnosed with a first malignant cancer (thyroid, melanoma, testicular, breast, lymphoma, leukemia, and CNS tumors).[41]
  - For all cancer types combined, among individuals who survived up to 5 years, the subsequent 5-year relative survival rate exceeded 95% by 7 years after diagnosis.
  - Most AYA cancer patients who survived at least 7 years after diagnosis experienced little difference in survival compared with the general population.
  - For specific cancer types, including CNS tumors, female breast cancer, Hodgkin lymphoma, and leukemia, evidence of excess mortality risk persisted, or re-emerged, more than 10 years after a cancer diagnosis.
  - Conditional relative survival was lowest for AYA patients with CNS tumors, although patients aged 15 to 29 years demonstrated a higher survival rate than did patients aged 30 to 39 years at the time of diagnosis of their CNS tumors.
- A separate analysis of 5-year survivors of AYA cancer (aged 15–39 years at diagnosis), also using SEER data (N = 282,969), demonstrated the following:[42]
  - The 10-year all-cause mortality rate decreased from 8.3% for those diagnosed between 1975 and 1984 to 5.4% for those diagnosed between 2005 and 2011.
  - The decrease in mortality primarily resulted from fewer deaths from the initial cancer.
- CCSS investigators compared chronic health conditions and all-cause and cause-specific mortality among 5,804 survivors of early-AYA cancer survivors (cancer diagnosis, age 15–20 years; median age, 42 years) and 5,804 childhood cancer survivors (cancer diagnosis, age <15 years; median age, 34 years) matched on primary cancer diagnosis.[43]
  - The SMR was 5.9 (95% CI, 5.5–6.2) for early-AYA survivors and 6.2 (95% CI, 5.8–6.6) for younger childhood cancer survivors, compared with the general population.
  - Early-AYA survivors had lower SMRs for death from health-related causes than did childhood cancer survivors (SMR, 4.8 [95% CI, 4.4–5.1] vs. 6.8 [95% CI, 6.2–7.4]), which was primarily evident more than 20 years after cancer diagnosis.
  - Early-AYA and childhood cancer survivors were at greater risk of developing severe and disabling, life-threatening, or fatal (grades 3–5) health conditions than were siblings of the same age (HR, 4.2 [95% CI, 3.7–4.8] for early-AYA and 5.6 [95% CI, 4.9–6.3] for childhood cancer survivors), although the risk was lower for early-AYA survivors than for childhood cancer survivors.
- In a retrospective, population-based cohort study from Kaiser Permanente, cause-specific mortality in 2-year survivors (N = 10,574) of AYA cancers (patients aged 13–39 years who were diagnosed between 1990 and 2012) was examined and compared with individuals without cancer.[45]
  - AYA cancer survivors were at a 10.4-fold increased risk of death compared with the matched noncancer cohort, and this risk remained elevated at more than 20 years after diagnosis (incidence rate ratio [IRR], 2.9).
  - Beginning at 15 years after diagnosis, the incidence of second cancer–related mortality exceeded the rate of recurrence-related mortality.
  - Mortality risk of suicide was doubled in AYA cancer survivors compared with the noncancer cohort.
- Chronic comorbidities were investigated in a retrospective, population-based cohort study of 6,778 2-year AYA cancer survivors diagnosed and monitored at Kaiser Permanente.[46]
  - Approximately 17% of the survivors developed more than one comorbidity. The most common comorbidities were dyslipidemia (22 per 1,000 person-years), hypertension (16 per 1,000 person-years), diabetes (10 per 1,000 person-years), thyroid disorders (9 per 1,000 person-years), and severe depression or anxiety (8 per 1,000 person-years).
  - IRRs were higher in survivors than in controls without a history of cancer for avascular necrosis (IRR, 8.25), followed by osteoporosis (IRR, 5.75), joint replacement (IRR, 3.89), stroke (IRR, 3.19), premature ovarian failure (IRR, 2.87), and cardiomyopathy or heart failure (IRR, 2.64).
  - For survivors of AYA cancer, the prevalence of multiple comorbidities approached 40% at 10 years after index date (a 2-year time point from diagnosis), compared with 20% for those without cancer (P < .001).

### Monitoring for Late Effects

Recognition of both acute and late modality–specific toxicity has motivated investigations evaluating the pathophysiology and prognostic factors for cancer treatment–related effects. Consequently, the results of late effects research have played an important role in the following areas:

- Changing pediatric cancer therapeutic approaches to reduce treatment-related mortality among survivors treated in more recent eras.[47]
- The development of risk counseling and health screening recommendations for long-term survivors by identifying the clinical and treatment characteristics of those at highest risk of therapy-related complications.[48]

The common late effects of pediatric cancer encompass several broad domains, including the following:

- Growth and development.
- Organ function.
- Reproductive capacity and health of offspring.
- Secondary carcinogenesis.
- Psychosocial sequelae related to the primary cancer, its treatment, or maladjustment associated with the cancer experience.

Late sequelae of therapy for childhood cancer can be anticipated based on therapeutic exposures, but the magnitude of risk and the manifestations in an individual patient are influenced by numerous factors. Multiple factors should be considered in the risk assessment for a given late effect (see Figure 3).[49]

Cancer-related factors:

- Organs or tissues affected by the cancer.
- Direct tissue effects.
- Cancer-induced organ dysfunction or other tissue effects.

Treatment-related factors:

- Radiation therapy: Total dose, fraction size, organ or tissue volume exposed.
- Chemotherapy: Agent type, dose-intensity, cumulative dose, schedule.
- Surgery: Technique, site, consequential organ dysfunction.
- HSCT.
- Combined-modality effects (therapeutic interactions).
- Blood product transfusion.
- Chronic graft-versus-host disease.

Host-related factors:

- Sex.
- Genetic predisposition.
- Premorbid, comorbid, posttreatment health states and exposures.
- Developmental status (age).
- Time from diagnosis/therapy.
- Inherent tissue sensitivities and capacity for normal tissue repair.
- Hormonal milieu.
- Socioeconomic status.
- Health habits.

Figure 3. Factors influencing morbidity and mortality of the childhood cancer survivor. Each arrow indicates a different factor affecting morbidity and mortality that exerts its effect along a continuum of care. Note that all effectors can begin exerting influence on morbidity during the period of cancer-directed therapy. Factors are separated into those that cannot be modified (red), those for which future interventions are plausible (yellow), and those for which there are known targets for interventions or areas in which therapy and surveillance have already been modified (blue). Reprinted from CA: A Cancer Journal for Clinicians (https://acsjournals.onlinelibrary.wiley.com/journal/15424863), Volume 68, Issue 2, Dixon SB, Bjornard KL, Alberts NM, et al., Factors influencing risk-based care of the childhood cancer survivor in the 21st century, Pages 133–152, Copyright © 2018 American Cancer Society, with permission from John Wiley and Sons.

Chart showing factors influencing morbidity and mortality in the childhood cancer survivor.

### Resources to Support Survivor Care

#### Risk-based screening

The need for long-term follow-up of childhood cancer survivors is supported by the American Society of Pediatric Hematology/Oncology, the International Society of Pediatric Oncology, the American Academy of Pediatrics, the Children’s Oncology Group (COG), and the Institute of Medicine. A risk-based medical follow-up is recommended, which includes a systematic plan for lifelong screening, surveillance, and prevention that incorporates risk estimates based on the following:[49]

- Previous cancer.
- Cancer therapy.
- Genetic predisposition.
- Lifestyle behaviors.
- Comorbid conditions.
- Sex.

Part of long-term follow-up also focuses on appropriate screening of educational and vocational progress. Specific treatments for childhood cancer, especially those that directly impact nervous system structures, may result in sensory, motor, and neurocognitive deficits that may have adverse effects on functional status, educational attainment, and future vocational opportunities. In support of this, a CCSS investigation observed the following:[50]

- Treatment with cranial radiation doses of 25 Gy or higher was associated with higher odds of unemployment (health related: OR, 3.47; 95% CI, 2.54–4.74; seeking work: OR, 1.77; 95% CI, 1.15–2.71).
- Unemployed survivors reported higher levels of poor physical functioning than employed survivors, had lower education and income, and were more likely to be publicly insured than unemployed siblings.

These data emphasize the importance of facilitating survivor access to individualized education services, which has been demonstrated to have a positive impact on education achievement.[51] These services may in turn enhance vocational opportunities.

In addition to risk-based screening for medical late effects, the impact of health behaviors on cancer-related health risks is also emphasized. Health-promoting behaviors are stressed for survivors of childhood cancer. Educational efforts focused on healthy lifestyle behaviors include the following:

- Abstinence from smoking, excess alcohol use, and illicit drug use to reduce the risk of organ toxicity and, potentially, subsequent neoplasms.
- Healthy dietary practices (e.g., a diet rich in plant foods and moderate in animal foods) [52] and active lifestyle to reduce treatment-related metabolic and cardiovascular complications.
- Regular physical activity to reduce neurocognitive problems and enhance psychological outcomes.[53,54]
  - Survivors who engaged in consistent physical activity over time had fewer neurocognitive problems, including difficulties with task efficiency, emotional regulation, organization, and memory. They also experienced larger neurocognitive improvements, compared with those who had inconsistent activity levels.[53]
  - Vigorous exercise in survivors has been associated with a lower prevalence of depression and somatization, as well as less impairment in physical functioning, general health and vitality, emotional role limitations, and mental health quality-of-life domains.[54]

Proactively addressing unhealthy and risky behaviors is pertinent because several research investigations confirm that long-term survivors use tobacco and alcohol and have inactive lifestyles despite their increased risk of cardiac, pulmonary, and metabolic late effects.[55-57]

#### Access to risk-based survivor care

Most childhood cancer survivors do not receive recommended risk-based care. The CCSS observed the following:

- 92.8% of survivors reported receiving some form of medical care in the previous year.[58]
- Nearly 40% reported receiving care that focused on their previous cancer (survivor-focused care).[58]
- Surveillance for new cases of cancer was very low in survivors at the highest risk of colon, breast, or skin cancer, suggesting that survivors and their physicians need education about the risk of subsequent neoplasms and recommended surveillance.[59]
- Sociodemographic factors have been linked to declining rates of follow-up care over time from diagnosis. CCSS participants who were male, had a household income of less than $20,000 per year, and had lower educational attainment (high school education or less) were more likely to report no care at their most recent follow-up survey. This trend is concerning because the prevalence of chronic health conditions increases with longer elapsed time from cancer diagnosis in adults treated for cancer during childhood.[60]
- A study that included 975 adult survivors of childhood cancer identified factors associated with attending the recommended risk-based, cancer-related medical visits. The relative risk of having a cancer-related visit was higher among survivors who:[61]
  - Assigned a greater importance to these visits.
  - Perceived a greater susceptibility to health problems.
  - Had experienced a cancer-related chronic health problem that was moderate to life-threatening.
  - Were seeing a primary care provider for a cancer-related problem.
  - Had received a cancer treatment care plan.
  - Expressed greater confidence in physicians’ abilities to address questions and concerns.

Access to health insurance appears to play an important role in risk-based survivor care.[62,63] Lack of access to health insurance affects the following:

- Cancer-related visits. In the CCSS, uninsured survivors were less likely than those privately insured to report a cancer-related visit (adjusted relative risk, 0.83; 95% CI, 0.75–0.91) or a cancer center visit (adjusted relative risk, 0.83; 95% CI, 0.71–0.98). Uninsured survivors had lower levels of utilization in all measures of care than privately insured survivors. In contrast, publicly insured survivors were more likely to report a cancer-related visit (adjusted relative risk, 1.22; 95% CI, 1.11–1.35) or a cancer center visit (adjusted relative risk, 1.41; 95% CI, 1.18–1.70) than were privately insured survivors.[62]
- Health care outcomes. In a study comparing health care outcomes for long-term AYA cancer survivors with young adults who have no cancer history, the proportion of uninsured survivors did not differ between the two groups.[64]
- Financial burden. Subgroups of adult survivors of childhood cancer may be at additional risk of health care barriers due to financial hardship. Younger survivors (aged 20–29 years), females, non-White survivors, and survivors reporting poorer health faced more cost barriers, which may inhibit the early detection of late effects.[64] Survivors are more likely than their siblings to forego needed medical care related to financial challenges.[65]

Overall, lack of health insurance—related to health issues, unemployment, and other societal factors—remains a significant concern for survivors of childhood cancer.[66,67] Legislation, including the Health Insurance Portability and Accountability Act (HIPAA),[68,69] has improved access and retention of health insurance among survivors, although the quality and limitations associated with these policies have not been well studied.

### Transition to Survivor Care

#### Long-term follow-up programs

Transition of care from the pediatric to adult health care setting is necessary for most childhood cancer survivors in the United States.

When available, multidisciplinary long-term follow-up programs in the pediatric cancer center work collaboratively with community physicians to provide care for childhood cancer survivors. This type of shared care has been proposed as the optimal model to facilitate coordination between the cancer center oncology team and community physician groups providing survivor care.[70]

An essential service of long-term follow-up programs is the organization of an individualized survivorship care plan that includes the following:

- Details about therapeutic interventions undertaken for childhood cancer and their potential health risks (e.g., chemotherapy type and cumulative dose, radiation treatment fields and dose, surgical procedures, blood product transfusions, and HSCT).
- Personalized health screening recommendations.
- Information about lifestyle factors that modify risks.

A CCSS investigation that evaluated perceptions of future health and cancer risk highlighted the importance of continuing education of survivors during long-term follow-up evaluations. A substantial subgroup of adult survivors reported a lack of concern about future health (24%) and subsequent cancer risks (35%), even after exposure to treatments associated with increased risks. These findings present concerns that survivors may be less likely to engage in beneficial screenings and risk-reduction activities.[71]

The CCSS evaluated the surveillance and screening practices of 11,337 childhood cancer survivors. They found that fewer than half of high-risk survivors at increased risk of developing SMNs or cardiac dysfunction received the recommended surveillance, which likely exposes them to preventable morbidity and mortality.[59]

- 27% of survivors and 20% of primary care providers (PCP) had a survivorship care plan. Survivors treated after 1990 were more likely to have a survivorship care plan.
- Survivorship care plan possession by high-risk survivors was associated with increased adherence to COG-recommended breast (22% vs. 8%), skin (35% vs. 23%), and cardiac (67% vs. 33%) surveillance. PCP survivorship care plan possession was associated with increased adherence to skin surveillance (40% vs. 23%).
- Among high-risk survivors, adherence increased for colorectal (14% to 41%, P < .001) and cardiac (22% to 38%, P < .001) surveillance and decreased for breast surveillance (38% to 13%, P < .001) between 2007 and 2016.
- For average-risk survivors, better adherence to American Cancer Society recommendations for breast (57%), cervical (84%), and colorectal (69%) screening was observed than with COG recommendations. PCP survivorship care plan possession was associated with increased adherence to breast and colorectal screening. Survivors were less adherent to breast screening than the general population and less adherent to cervical screening than siblings.

For survivors who have not been provided with this information, the COG offers a template that can be used by survivors to organize a personal treatment summary. For more information, see the COG Survivorship Guidelines, Appendix 1 (http://www.survivorshipguidelines.org/pdf/COG_LTFU_Guidelines_AppendixI_v4.pdf).

#### COG long-term follow-up guidelines for childhood and AYA cancer survivors

To facilitate survivor and provider access to succinct information to guide risk-based care, COG investigators have organized a compendium of exposure- and risk-based health surveillance recommendations, with the goal of standardizing the care of childhood cancer survivors.[72]

The compendium of resources includes the following:

- Long-Term Follow-Up Guidelines. COG Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/) are appropriate for asymptomatic survivors presenting for routine exposure-based medical evaluation 2 or more years after completion of therapy.
- Health Links. Patient education materials called Health Links provide detailed information on guideline-specific topics to enhance health maintenance and promotion among this population of cancer survivors.[73]

Information concerning late effects is summarized in tables throughout this summary.

Several groups have undertaken research to evaluate the yield from risk-based screening as recommended by the COG and other pediatric oncology cooperative groups.[7,74,75] Pertinent considerations in interpreting the results of these studies include the following:

- Variability in the cohort’s age at treatment.
- Age at screening.
- Time from cancer treatment.
- Participation bias.

Collectively, these studies demonstrate that screening identifies a substantial proportion of individuals with previously unrecognized, treatment-related health complications of varying degrees of severity. Study results have also identified low-yield evaluations that have encouraged revisions of screening recommendations. Ongoing research is evaluating the cost effectiveness of screening in the context of consideration of benefits, risks, and harms.

### References

National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Lorenzi MF, Xie L, Rogers PC, et al.: Hospital-related morbidity among childhood cancer survivors in British Columbia, Canada: report of the childhood, adolescent, young adult cancer survivors (CAYACS) program. Int J Cancer 128 (7): 1624-31, 2011.21280033
Rebholz CE, Reulen RC, Toogood AA, et al.: Health care use of long-term survivors of childhood cancer: the British Childhood Cancer Survivor Study. J Clin Oncol 29 (31): 4181-8, 2011.21947833
Armstrong GT, Kawashima T, Leisenring W, et al.: Aging and risk of severe, disabling, life-threatening, and fatal events in the childhood cancer survivor study. J Clin Oncol 32 (12): 1218-27, 2014.24638000
Teepen JC, Kok JL, Feijen EAM, et al.: Questionnaire- and linkage-based outcomes in Dutch childhood cancer survivors: Methodology of the DCCSS LATER study part 1. Cancer Med 12 (6): 7588-7602, 2023.36519590
Geenen MM, Cardous-Ubbink MC, Kremer LC, et al.: Medical assessment of adverse health outcomes in long-term survivors of childhood cancer. JAMA 297 (24): 2705-15, 2007.17595271
Hudson MM, Ness KK, Gurney JG, et al.: Clinical ascertainment of health outcomes among adults treated for childhood cancer. JAMA 309 (22): 2371-81, 2013.23757085
Feijen EAM, Teepen JC, van Dulmen-den Broeder E, et al.: Clinical evaluation of late outcomes in Dutch childhood cancer survivors: Methodology of the DCCSS LATER 2 study. Pediatr Blood Cancer 70 (5): e30212, 2023.36651687
Kurt BA, Nolan VG, Ness KK, et al.: Hospitalization rates among survivors of childhood cancer in the Childhood Cancer Survivor Study cohort. Pediatr Blood Cancer 59 (1): 126-32, 2012.22180128
Zhang Y, Lorenzi MF, Goddard K, et al.: Late morbidity leading to hospitalization among 5-year survivors of young adult cancer: a report of the childhood, adolescent and young adult cancer survivors research program. Int J Cancer 134 (5): 1174-82, 2014.24037993
Sørensen GV, Winther JF, de Fine Licht S, et al.: Long-Term Risk of Hospitalization Among Five-Year Survivors of Childhood Leukemia in the Nordic Countries. J Natl Cancer Inst 111 (9): 943-951, 2019.30753563
Emerson MA, Olshan AF, Chow EJ, et al.: Hospitalization and Mortality Outcomes Among Childhood Cancer Survivors by Race, Ethnicity, and Time Since Diagnosis. JAMA Netw Open 5 (6): e2219122, 2022.35763295
Streefkerk N, Tissing WJE, Korevaar JC, et al.: A detailed insight in the high risks of hospitalizations in long-term childhood cancer survivors-A Dutch LATER linkage study. PLoS One 15 (5): e0232708, 2020.32427994
Berbis J, Michel G, Chastagner P, et al.: A French cohort of childhood leukemia survivors: impact of hematopoietic stem cell transplantation on health status and quality of life. Biol Blood Marrow Transplant 19 (7): 1065-72, 2013.23618717
Phillips SM, Padgett LS, Leisenring WM, et al.: Survivors of childhood cancer in the United States: prevalence and burden of morbidity. Cancer Epidemiol Biomarkers Prev 24 (4): 653-63, 2015.25834148
Bhakta N, Liu Q, Ness KK, et al.: The cumulative burden of surviving childhood cancer: an initial report from the St Jude Lifetime Cohort Study (SJLIFE). Lancet 390 (10112): 2569-2582, 2017.28890157
Salloum R, Chen Y, Yasui Y, et al.: Late Morbidity and Mortality Among Medulloblastoma Survivors Diagnosed Across Three Decades: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 37 (9): 731-740, 2019.30730781
Streefkerk N, Teepen JC, Feijen EAM, et al.: The cumulative burden of self-reported, clinically relevant outcomes in long-term childhood cancer survivors and implications for survivorship care: A DCCSS LATER study. Cancer 130 (8): 1349-1358, 2024.38100618
Esbenshade AJ, Lu L, Friedman DL, et al.: Accumulation of Chronic Disease Among Survivors of Childhood Cancer Predicts Early Mortality. J Clin Oncol 41 (20): 3629-3641, 2023.37216619
Ehrhardt MJ, Williams AM, Liu Q, et al.: Cumulative burden of chronic health conditions among adolescent and young adult survivors of childhood cancer: Identification of vulnerable groups at key medical transitions. Pediatr Blood Cancer 68 (6): e29030, 2021.33788394
Vuotto SC, Krull KR, Li C, et al.: Impact of chronic disease on emotional distress in adult survivors of childhood cancer: A report from the Childhood Cancer Survivor Study. Cancer 123 (3): 521-528, 2017.27764524
Hudson MM, Oeffinger KC, Jones K, et al.: Age-dependent changes in health status in the Childhood Cancer Survivor cohort. J Clin Oncol 33 (5): 479-91, 2015.25547510
Liu Q, Leisenring WM, Ness KK, et al.: Racial/Ethnic Differences in Adverse Outcomes Among Childhood Cancer Survivors: The Childhood Cancer Survivor Study. J Clin Oncol 34 (14): 1634-43, 2016.27001569
Ehrhardt MJ, Bhakta N, Liu Q, et al.: Absence of Basal Cell Carcinoma in Irradiated Childhood Cancer Survivors of Black Race: A Report from the St. Jude Lifetime Cohort Study. Cancer Epidemiol Biomarkers Prev 25 (9): 1356-60, 2016.27365149
Turcotte LM, Liu Q, Yasui Y, et al.: Temporal Trends in Treatment and Subsequent Neoplasm Risk Among 5-Year Survivors of Childhood Cancer, 1970-2015. JAMA 317 (8): 814-824, 2017.28245323
Gibson TM, Mostoufi-Moab S, Stratton KL, et al.: Temporal patterns in the risk of chronic health conditions in survivors of childhood cancer diagnosed 1970-99: a report from the Childhood Cancer Survivor Study cohort. Lancet Oncol 19 (12): 1590-1601, 2018.30416076
Ness KK, Hudson MM, Jones KE, et al.: Effect of Temporal Changes in Therapeutic Exposure on Self-reported Health Status in Childhood Cancer Survivors. Ann Intern Med 166 (2): 89-98, 2017.27820947
Armstrong GT, Chen Y, Yasui Y, et al.: Reduction in Late Mortality among 5-Year Survivors of Childhood Cancer. N Engl J Med 374 (9): 833-42, 2016.26761625
Holmqvist AS, Chen Y, Wu J, et al.: Late mortality after autologous blood or marrow transplantation in childhood: a Blood or Marrow Transplant Survivor Study-2 report. Blood 131 (24): 2720-2729, 2018.29661789
Bagnasco F, Caruso S, Andreano A, et al.: Late mortality and causes of death among 5-year survivors of childhood cancer diagnosed in the period 1960-1999 and registered in the Italian Off-Therapy Registry. Eur J Cancer 110: 86-97, 2019.30772657
Byrne J, Schmidtmann I, Rashid H, et al.: Impact of era of diagnosis on cause-specific late mortality among 77 423 five-year European survivors of childhood and adolescent cancer: The PanCareSurFup consortium. Int J Cancer 150 (3): 406-419, 2022.34551126
Kilsdonk E, van Dulmen-den Broeder E, van Leeuwen FE, et al.: Late Mortality in Childhood Cancer Survivors according to Pediatric Cancer Diagnosis and Treatment Era in the Dutch LATER Cohort. Cancer Invest 40 (5): 413-424, 2022.35175864
Dixon SB, Liu Q, Chow EJ, et al.: Specific causes of excess late mortality and association with modifiable risk factors among survivors of childhood cancer: a report from the Childhood Cancer Survivor Study cohort. Lancet 401 (10386): 1447-1457, 2023.37030315
Mertens AC, Yong J, Dietz AC, et al.: Conditional survival in pediatric malignancies: analysis of data from the Childhood Cancer Survivor Study and the Surveillance, Epidemiology, and End Results Program. Cancer 121 (7): 1108-17, 2015.25557134
Fidler MM, Reulen RC, Winter DL, et al.: Long term cause specific mortality among 34 489 five year survivors of childhood cancer in Great Britain: population based cohort study. BMJ 354: i4351, 2016.27586237
Holmqvist AS, Chen Y, Wu J, et al.: Assessment of Late Mortality Risk After Allogeneic Blood or Marrow Transplantation Performed in Childhood. JAMA Oncol 4 (12): e182453, 2018.30054602
Dixon SB, Chen Y, Yasui Y, et al.: Reduced Morbidity and Mortality in Survivors of Childhood Acute Lymphoblastic Leukemia: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 38 (29): 3418-3429, 2020.32706634
Turcotte LM, Whitton JA, Leisenring WM, et al.: Chronic conditions, late mortality, and health status after childhood AML: a Childhood Cancer Survivor Study report. Blood 141 (1): 90-101, 2023.36037430
Ehrhardt MJ, Liu Q, Dixon SB, et al.: Association of Modifiable Health Conditions and Social Determinants of Health With Late Mortality in Survivors of Childhood Cancer. JAMA Netw Open 6 (2): e2255395, 2023.36763361
Chen C, Qin N, Wang M, et al.: Cancer germline predisposing variants and late mortality from subsequent malignant neoplasms among long-term childhood cancer survivors: a report from the St Jude Lifetime Cohort and the Childhood Cancer Survivor Study. Lancet Oncol 24 (10): 1147-1156, 2023.37797633
Anderson C, Smitherman AB, Nichols HB: Conditional relative survival among long-term survivors of adolescent and young adult cancers. Cancer 124 (14): 3037-3043, 2018.29742278
Anderson C, Nichols HB: Trends in Late Mortality Among Adolescent and Young Adult Cancer Survivors. J Natl Cancer Inst 112 (10): 994-1002, 2020.32123906
Suh E, Stratton KL, Leisenring WM, et al.: Late mortality and chronic health conditions in long-term survivors of early-adolescent and young adult cancers: a retrospective cohort analysis from the Childhood Cancer Survivor Study. Lancet Oncol 21 (3): 421-435, 2020.32066543
Rossetti S, Juul SJ, Eriksson F, et al.: Long-term cause-specific mortality in adolescent and young adult Hodgkin lymphoma patients treated with contemporary regimens-A nationwide Danish cohort study. Br J Haematol 205 (4): 1374-1382, 2024.38867552
Armenian SH, Xu L, Cannavale KL, et al.: Cause-specific mortality in survivors of adolescent and young adult cancer. Cancer 126 (10): 2305-2316, 2020.32129881
Chao C, Bhatia S, Xu L, et al.: Chronic Comorbidities Among Survivors of Adolescent and Young Adult Cancer. J Clin Oncol 38 (27): 3161-3174, 2020.32673152
Hudson MM, Armenian SH, Armstrong GT, et al.: Optimization of Health and Extension of Lifespan Through Childhood Cancer Survivorship Research. J Clin Oncol 36 (21): 2133-2134, 2018.29874131
Kremer LC, Mulder RL, Oeffinger KC, et al.: A worldwide collaboration to harmonize guidelines for the long-term follow-up of childhood and young adult cancer survivors: a report from the International Late Effects of Childhood Cancer Guideline Harmonization Group. Pediatr Blood Cancer 60 (4): 543-9, 2013.23281199
Dixon SB, Bjornard KL, Alberts NM, et al.: Factors influencing risk-based care of the childhood cancer survivor in the 21st century. CA Cancer J Clin 68 (2): 133-152, 2018.29377070
Kirchhoff AC, Leisenring W, Krull KR, et al.: Unemployment among adult survivors of childhood cancer: a report from the childhood cancer survivor study. Med Care 48 (11): 1015-25, 2010.20940653
Mitby PA, Robison LL, Whitton JA, et al.: Utilization of special education services and educational attainment among long-term survivors of childhood cancer: a report from the Childhood Cancer Survivor Study. Cancer 97 (4): 1115-26, 2003.12569614 22456345
Lan T, Wang M, Ehrhardt MJ, et al.: Adherence to healthy diet and risk of cardiovascular disease in adult survivors of childhood cancer in the St. Jude Lifetime Cohort: a cross-sectional study. BMC Med 21 (1): 242, 2023.37400811
Barlow-Krelina E, Chen Y, Yasui Y, et al.: Consistent Physical Activity and Future Neurocognitive Problems in Adult Survivors of Childhood Cancers: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 38 (18): 2041-2052, 2020.32330104
Tonorezos ES, Ford JS, Wang L, et al.: Impact of exercise on psychological burden in adult survivors of childhood cancer: A report from the Childhood Cancer Survivor Study. Cancer 125 (17): 3059-3067, 2019.31067357
Lown EA, Hijiya N, Zhang N, et al.: Patterns and predictors of clustered risky health behaviors among adult survivors of childhood cancer: A report from the Childhood Cancer Survivor Study. Cancer 122 (17): 2747-56, 2016.27258389
Gibson TM, Liu W, Armstrong GT, et al.: Longitudinal smoking patterns in survivors of childhood cancer: An update from the Childhood Cancer Survivor Study. Cancer 121 (22): 4035-43, 2015.26287647
Devine KA, Mertens AC, Whitton JA, et al.: Factors associated with physical activity among adolescent and young adult survivors of early childhood cancer: A report from the childhood cancer survivor study (CCSS). Psychooncology 27 (2): 613-619, 2018.28805953
Mueller EL, Park ER, Kirchhoff AC, et al.: Insurance, chronic health conditions, and utilization of primary and specialty outpatient services: a Childhood Cancer Survivor Study report. J Cancer Surviv 12 (5): 639-646, 2018.29943170
Yan AP, Chen Y, Henderson TO, et al.: Adherence to Surveillance for Second Malignant Neoplasms and Cardiac Dysfunction in Childhood Cancer Survivors: A Childhood Cancer Survivor Study. J Clin Oncol 38 (15): 1711-1722, 2020.32142393
Casillas J, Oeffinger KC, Hudson MM, et al.: Identifying Predictors of Longitudinal Decline in the Level of Medical Care Received by Adult Survivors of Childhood Cancer: A Report from the Childhood Cancer Survivor Study. Health Serv Res 50 (4): 1021-42, 2015.25600956
Ford JS, Tonorezos ES, Mertens AC, et al.: Barriers and facilitators of risk-based health care for adult survivors of childhood cancer: A report from the Childhood Cancer Survivor Study. Cancer 126 (3): 619-627, 2020.31626337
Casillas J, Castellino SM, Hudson MM, et al.: Impact of insurance type on survivor-focused and general preventive health care utilization in adult survivors of childhood cancer: the Childhood Cancer Survivor Study (CCSS). Cancer 117 (9): 1966-75, 2011.21509774
Keegan TH, Tao L, DeRouen MC, et al.: Medical care in adolescents and young adult cancer survivors: what are the biggest access-related barriers? J Cancer Surviv 8 (2): 282-92, 2014.24408440
Kirchhoff AC, Lyles CR, Fluchel M, et al.: Limitations in health care access and utilization among long-term survivors of adolescent and young adult cancer. Cancer 118 (23): 5964-72, 2012.23007632
Nathan PC, Huang IC, Chen Y, et al.: Financial Hardship in Adult Survivors of Childhood Cancer in the Era After Implementation of the Affordable Care Act: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 41 (5): 1000-1010, 2023.36179267
Kirchhoff AC, Kuhlthau K, Pajolek H, et al.: Employer-sponsored health insurance coverage limitations: results from the Childhood Cancer Survivor Study. Support Care Cancer 21 (2): 377-83, 2013.22717916
Kuhlthau KA, Nipp RD, Shui A, et al.: Health insurance coverage, care accessibility and affordability for adult survivors of childhood cancer: a cross-sectional study of a nationally representative database. J Cancer Surviv 10 (6): 964-971, 2016.27072683
Park ER, Kirchhoff AC, Zallen JP, et al.: Childhood Cancer Survivor Study participants' perceptions and knowledge of health insurance coverage: implications for the Affordable Care Act. J Cancer Surviv 6 (3): 251-9, 2012.22592507
Warner EL, Park ER, Stroup A, et al.: Childhood cancer survivors' familiarity with and opinions of the Patient Protection and Affordable Care Act. J Oncol Pract 9 (5): 246-50, 2013.23943900
Jacobs LA, Shulman LN: Follow-up care of cancer survivors: challenges and solutions. Lancet Oncol 18 (1): e19-e29, 2017.28049574
Gibson TM, Li C, Armstrong GT, et al.: Perceptions of future health and cancer risk in adult survivors of childhood cancer: A report from the Childhood Cancer Survivor Study. Cancer 124 (16): 3436-3444, 2018.29938398
Landier W, Bhatia S, Eshelman DA, et al.: Development of risk-based guidelines for pediatric cancer survivors: the Children's Oncology Group Long-Term Follow-Up Guidelines from the Children's Oncology Group Late Effects Committee and Nursing Discipline. J Clin Oncol 22 (24): 4979-90, 2004.15576413
Eshelman D, Landier W, Sweeney T, et al.: Facilitating care for childhood cancer survivors: integrating children's oncology group long-term follow-up guidelines and health links in clinical practice. J Pediatr Oncol Nurs 21 (5): 271-80, 2004 Sep-Oct.15381795
Landier W, Armenian SH, Lee J, et al.: Yield of screening for long-term complications using the children's oncology group long-term follow-up guidelines. J Clin Oncol 30 (35): 4401-8, 2012.23091100
Wasilewski-Masker K, Mertens AC, Patterson B, et al.: Severity of health conditions identified in a pediatric cancer survivor program. Pediatr Blood Cancer 54 (7): 976-82, 2010.20108334

## Subsequent Neoplasms

Subsequent neoplasms (SNs) are defined as histologically distinct neoplasms developing at least 2 months after completion of treatment for the primary malignancy. SNs may be benign or malignant. Childhood cancer survivors have increased risks of developing SNs that are multifactorial in etiology and vary according to the following:

- Host factors (e.g., genetics, immune function, hormone status).
- Primary cancer therapy.
- Environmental exposures.
- Lifestyle factors.

SNs are the leading cause of nonrelapse late mortality (standardized mortality ratio, 15.2; 95% confidence interval [CI], 13.9–16.6).[1] The Childhood Cancer Survivor Study (CCSS) reported the following 30-year cumulative incidence rates:[2]

- All SNs: 20.5% (95% CI, 19.1%–21.8%).
- Nonmelanoma skin cancer (NMSC): 9.1% (95% CI, 8.1%–10.1%).
- SNs with malignant histologies (excluding NMSC): 7.9% (95% CI, 7.2%–8.5%).
- Meningioma: 3.1% (95% CI, 2.5%–3.8%).

This represents a sixfold increased risk of SNs among cancer survivors, compared with the general population.[2]

Several studies have described the excess risk of SNs.[3,4]

Evidence (excess risk of SNs):

1. A population-based study that leveraged registry data evaluated early second primary tumors occurring within 5 years of a first primary cancer diagnosed before age 15 years (1971–2010).[5]
  - Early second primary tumors developed in 0.4% of cancer survivors, which is a sevenfold excess risk (standardized incidence ratio [SIR], 7.7; 95% CI, 6.7–8.9).
  - Excess risk was higher among children diagnosed between 1981 and 1990 (SIR, 9.5; 95% CI, 7.1–12.5), compared with earlier or later decades (SIR, 6.5–7.5).
  - Cancer predisposition syndromes were implicated in 21% of children with early second primary tumors and suspected in another 5%.
2. An international case-control study pooled data for an analysis of meningioma risk after treatment for childhood cancer. The study evaluated the magnitude of radiation dose–response association, potential modifiers of radiation risks, and the role of chemotherapy.[6]
  - Increasing radiation dose was associated with increased risk of meningioma (excess odds ratio [OR]/Gy, 1.44; 95% CI, 0.6–3.6), without evidence of departure from linearity.
  - Exposure to radiation doses of 24 Gy or higher was associated with more than 30-fold higher odds of developing a meningioma (OR, 33.7; 95% CI, 14.1–80.3).
  - Patients aged 10 years or older at treatment had a significantly lower radiation dose–response association compared with those treated before the age of 10 years (excess OR/Gy, 0.57; 95% CI, 0.18–1.91 vs. 2.20; 95% CI, 0.87–6.31).
  - Treatment with methotrexate was associated with an increased risk of meningioma (OR, 3.43; 95% CI, 1.56–7.57), but without evidence of a dose-response association or interaction with radiation dose.
  - Meningioma risk associated with radiation exposure remained significantly elevated 30 years after treatment (excess OR/Gy, 3.76; 95% CI, 0.77–29.15).
3. A CCSS cohort reported on any new SN (including malignant neoplasms, NMSCs, benign meningiomas, and other benign neoplasms) occurring after age 40 years.[3]
  - At the age of 55 years, the cumulative incidence of any new SN was 34.6%. The incidence of malignant SNs was 16.3%.
  - Female sex and therapeutic radiation exposure were associated with an increased risk of developing SNs in multivariate analysis.
  Prolonged follow-up has established that multiple SNs are common among aging childhood cancer survivors.[7,8]
4. The CCSS also reported the following:[4]
  - Individuals treated in more recent treatment eras experienced decreased risk of SNs (including subsequent malignancies, NMSCs, and benign meningiomas) compared with those treated earlier. This lower risk was attributed to decreased exposure to therapeutic radiation.
  - However, individuals treated in the 1990s remain at increased risk of SNs compared with the general population.
5. CCSS investigators evaluated morbidity and mortality associated with meningioma among 4,221 participants treated with cranial radiation therapy.[9]
  - The cumulative incidence of subsequent meningioma by age 40 years was 5.6% in this group of patients, and the incidence was without demonstrable plateau.
  - Risk factors for subsequent meningioma included female sex (hazard ratio [HR], 1.7; 95% CI, 1.2–2.3) and higher cranial radiation dose (HR, 2.6; 95% CI, 1.6–4.2 after 30 Gy or higher).
  - Among survivors reporting meningiomas, the risk of neurological sequelae occurring 5 or more years after primary cancer diagnosis was increased for seizures (HR, 10.0; 95% CI, 7.0–15.3); auditory-vestibular-visual sensory deficits (HR, 2.3; 95% CI, 1.3–4.0); focal neurological dysfunction (HR, 4.9; 95% CI, 3.2–7.5); and severe headaches (HR, 3.2; 95% CI, 1.9–5.4).
  - With a median follow-up of 72 months after meningioma diagnosis, 13% of the patients had died, with six deaths attributed to meningioma.
6. Dutch Childhood Oncology Group (DCOG)–LATER investigators evaluated the cumulative meningioma incidence and performed excess relative risk modeling of benign meningiomas in childhood cancer patients.[10]
  - Among 5,843 childhood cancer survivors (median follow-up, 23.3 years; range, 5.0–52.2 years), 97 patients developed a benign meningioma, including 80 after full-volume cranial radiation and 14 after partial-volume cranial radiation.
  - The 40-year cumulative incidence of meningioma after any cranial radiation was 12.4% (95% CI, 9.8%–15.2%).
  - Compared with cranial radiation doses of 1 to 19 Gy, no cranial radiation was associated with a low meningioma risk (HR, 0.04; 95% CI, 0.01–0.15), while increased risks were observed for doses of 20 to 39 Gy (HR, 1.66; 95% CI, 0.83–3.33) and 40 Gy or higher (HR, 2.81; 95% CI, 1.30–6.08).
  - Survivors diagnosed before the age of 5 years showed significantly increased risks (HR, 2.38; 95% CI, 1.39–4.07) compared with patients diagnosed between the ages of 10 and 17 years.
  - Radiation volume was not significantly associated with increased risk (HR for full vs. partial volume, 1.66; 95% CI, 0.86–3.22) and dose effects did not vary significantly according to exposure age or radiation volume.
  - Treatment with carboplatin was associated with meningioma risk (HR, 3.55; 95% CI, 1.62–7.78), but a dose-response was not observed, and all nine exposed cases had received high-dose cranial radiation.
  - In a follow-up study from the DCOG-LATER cohort, 90% of survivors with meningioma presented with symptoms rather than through late effects clinic screening, and 32% of survivors presented with synchronous meningiomas.[11]
7. CCSS investigators have also evaluated associations between chemotherapy and subsequent malignant neoplasms (SMNs) among nonirradiated, long-term survivors.[12]
  - Of 1,498 SMNs in 1,344 survivors, 229 occurred in 206 survivors who were treated with chemotherapy only.
  - The 30-year SMN cumulative incidence was 3.9% for the chemotherapy-only group, 9.0% for the chemotherapy-plus-radiation group, 10.8% for the radiation-only group, and 3.4% for the neither-treatment group.
  - SIRs for SMNs were increased for any SMN (SIR, 2.8), subsequent leukemia/lymphoma (SIR, 1.9), breast cancer (SIR, 4.6), soft tissue sarcoma (SIR, 3.4), thyroid cancer (SIR, 3.8), and melanoma (SIR, 2.3).
  - The SMN rate was significantly associated with exposure to platinum chemotherapy doses higher than 750 mg/m^2^ (relative rate, 2.7) and alkylating agents (relative rate, 1.2 per 5,000 mg/m^2^).
  - The breast cancer rate showed a linear dose response (relative rate, 1.3 per 100 mg/m^2^) with anthracycline exposure.
8. DCOG-LATER investigators evaluated the contribution of chemotherapy to solid cancer risk in a large cohort of childhood cancer survivors diagnosed between 1963 and 2001 (median follow-up, 20.7 years).[13]
  - The 25-year cumulative SN incidence was 3.9% and did not change across decades.
  - Survivors treated with doxorubicin exhibited a dose-dependent increased risk of all solid cancers and breast cancer. This relationship was stronger in survivors with Li-Fraumeni syndrome–associated childhood cancers (leukemia, central nervous system [CNS], and sarcomas other than Ewing) than in survivors of other cancers.
  - Among female survivors who did not receive chest radiation or total-body irradiation (TBI) and developed breast cancer (n = 31), HRs for doxorubicin dose tertiles were 1.3 (95% CI, 0.3–6.1), 5.6 (95% CI, 1.9–16.2), and 9.9 (95% CI, 4.2–23.8).
  - A dose-response relationship was confirmed with cyclophosphamide and subsequent sarcoma, particularly bone sarcoma. The HR for subsequent sarcoma was 3.1 (95% CI, 1.5–6.0) for survivors who received cyclophosphamide at a dose greater than 9,400 mg/m^2^ and 2.6 (95% CI, 1.3–5.2) for those who received ifosfamide.
9. St. Jude Life (SJLIFE) cohort study investigators assessed the contribution of pathogenic and likely pathogenic variants in cancer predisposition genes to SN risk in childhood cancer survivors.[14]
  - Of 3,006 study participants evaluated by whole-genome sequencing (30-fold), 1,120 SNs were diagnosed among 439 survivors (14.6%), and 175 pathogenic or likely pathogenic variants were identified in 5.8% of survivors. The prevalence of a pathogenic or likely pathogenic variant among nonirradiated survivors with SNs was much higher, at 18%.
  - Variants were associated with significantly increased rates of breast cancer (relative risk [RR], 13.9) and sarcoma (RR, 10.6) among irradiated survivors and with developing any SN (RR, 4.7), breast cancer (RR, 7.7), nonmelanoma skin cancer (RR, 11), and two or more histologically distinct SNs (RR, 18.6).
  - Variant carriers did not have an increased rate of meningioma or thyroid cancer.

The incidence and type of SNs depend on the following:

- Primary cancer diagnosis.
- Type of therapy received.
- Presence of genetic conditions.

Unique associations with specific therapeutic exposures have resulted in the classification of SNs into the following two distinct groups:

- Myelodysplastic syndrome postcytotoxic therapy (MDS-pCT) and acute myeloid leukemia postcytotoxic therapy (AML-pCT) (previously termed t-MDS and t-AML).
- Therapy-related solid SNs.

### Myelodysplastic Syndrome and Acute Myeloid Leukemia Postcytotoxic Therapy (MDS-pCT and AML-pCT)

Subsequent primary leukemias have been reported in survivors of Hodgkin lymphoma, leukemia, sarcoma, CNS tumors, non-Hodgkin lymphoma, neuroblastoma, and Wilms tumor. In a cohort of nearly 70,000 5-year childhood cancer survivors, survivors had a fourfold increased risk (SIR, 3.7) of developing a leukemia, with an absolute excess risk of 7.5. Specifically, a sixfold relative risk of developing a myeloid leukemia (SIR, 5.8) was reported.[15]

- The risk remained significantly elevated beyond 20 years from the first primary malignancy (SIR, 2.4).
- Hodgkin lymphoma survivors had the greatest excess risk of developing a subsequent leukemia (SIR, 7.9) and specifically a myeloid leukemia (SIR, 12.1), with the largest excess risk seen before 20 years of follow-up.

A pooled analysis examined all published studies with detailed treatment data for children with cancer diagnosed between 1930 and 2000. Treatment data included estimated radiation doses to the active bone marrow and doses of specific chemotherapy agents. In this report, 147 cases of second primary leukemia (69% of cases were AML) were matched to 522 controls.[16]

- After controlling for other therapies, topoisomerase II inhibitor therapy was associated with an increased risk of second AML (no radiation and >2,500 mg/m^2^ vs. none: OR, 14.3; 95% CI, 2.7–75.1).
- Radiation dose to the active bone marrow was also associated with an increased risk of second AML among patients who did not receive chemotherapy (>0–12 Gy: OR, 4.9; 95% CI, 0.95–25.6) but not among those who received chemotherapy.
- Second primary leukemias were most likely to occur in the first decade after cancer treatment.[17]

Characteristics of MDS-pCT and AML-pCT include the following:[18,19]

- A short latency (<10 years from primary cancer diagnosis). The risk of MDS-pCT or AML-pCT plateaus after 10 to 15 years. Although the risk of subsequent leukemia remains significantly elevated beyond 15 years from primary diagnosis (SIR, 3.5; 95% CI, 1.9–6.0), these events are relatively rare, with an absolute excess risk of 0.02 cases per 1,000 person-years.[19]
- An association with alkylating agents and/or topoisomerase II inhibitors.

Based on the updated definitions from the World Health Organization, MDS-pCT and AML-pCT are clonal disorders, which arise in patients previously exposed to cytotoxic therapy, either chemotherapy or large-field radiation therapy, for an unrelated neoplasm.[20] The following two types of MDS-pCT and AML-pCT are the most frequently observed among survivors:

- Alkylating agent–related type: Alkylating agents associated with MDS-pCT and AML-pCT include cyclophosphamide, ifosfamide, mechlorethamine, melphalan, busulfan, nitrosoureas, chlorambucil, and dacarbazine.[21]
  The risk of alkylating agent–related MDS or AML is dose dependent, with a latency of 3 to 5 years after exposure; it is associated with abnormalities involving chromosomes 5 (-5/del(5q)) and 7 (-7/del(7q)).[21]
- Topoisomerase II inhibitor–related type: Topoisomerase II inhibitor agents include etoposide, teniposide, and anthracycline-related drugs.
  Most of the translocations observed in patients exposed to topoisomerase II inhibitors disrupt a breakpoint cluster region between exons 5 and 11 of the band 11q23 and fuse KMT2A with a partner gene.[21] Topoisomerase II inhibitor–related AML presents as overt leukemia after a latency of 6 months to 3 years and is associated with balanced translocations involving chromosome bands 11q23 or 21q22.[22]

For more information, see the Therapy-Related AML and Therapy-Related Myelodysplastic Neoplasms section in Childhood Acute Myeloid Leukemia Treatment.

### Therapy-Related Solid SNs

Therapy-related solid SNs represent 80% of all SNs, demonstrate a strong relationship with radiation exposure, and are characterized by a latency that exceeds 10 years. The risk of solid SNs continues to increase with longer follow-up. The risk of solid SNs is highest when the following occur:[4,13]

- Younger age at time of radiation exposure.
- High total dose of radiation.
- Longer period of follow-up after radiation exposure.

The histological subtypes of solid SNs encompass a neoplastic spectrum ranging from benign and low-grade malignant lesions (e.g., NMSC, meningiomas) to high-grade malignancies (e.g., breast cancers, glioblastomas) (see Figure 4).[4,13,23,24]

Figure 4. Fitted radiation dose-response by type of second cancer, based on previously published studies of second sarcoma, skin, meningioma, salivary gland, glioma, breast, and thyroid gland. The order of second cancers from top to bottom in the graph is the same as in the key to the right of the panel. Reprinted from International Journal of Radiation Oncology*Biology*Physics (https://www.sciencedirect.com/journal/international-journal-of-radiation-oncology-biology-physics), Volume 94, Issue 4, Inskip PD, Sigurdson AJ, Veiga L, et al., Radiation-Related New Primary Solid Cancers in the Childhood Cancer Survivor Study: Comparative Radiation Dose Response and Modification of Treatment Effects, Pages 800–807, Copyright © 2016, with permission from Elsevier.

Graph showing fitted radiation dose (Gy) response by type of second cancer: sarcoma, skin cancer (BCC), meningioma, salivary gland cancer, glioma, breast cancer, and thyroid cancer.

Solid SNs in childhood cancer survivors most commonly involve the following:[4,13,23,25-28]

- Breast.
- Thyroid.
- CNS.
- Bone and soft tissue.
- Skin.

With longer follow-up of adult survivors of childhood cancer cohorts, epithelial neoplasms have been observed in the following:[13,29]

- Lung.
- Gastrointestinal tract.
- Oral cavity.
- Genitourinary system.
- Kidney.

Benign and low-grade SNs, including NMSCs and meningiomas, have also been observed with increasing prevalence in survivors who were treated with radiation therapy for childhood cancer.[4,10,30]

#### Subsequent neoplasms after hematopoietic stem cell transplant (HSCT)

Recipients of HSCT are treated with high-dose chemotherapy and, often, TBI, which makes their risk of SNs unique from that of the general oncology population.

- Among 4,318 first-time allogeneic HSCT recipients treated for AML and chronic myeloid leukemia between 1986 and 2005, and conditioned with high-dose busulfan and cyclophosphamide (Bu-Cy), 66 solid cancers were reported at a median of 6 years post-HSCT.[31]
  - The cumulative incidence of new solid cancers was 0.9% at 5 years and 2.4% at 10 years and appears to be similar, regardless of exposure to radiation.
  - Bu-Cy conditioning without TBI was associated with higher risks of solid SNs than in the general population.
  - Chronic graft-versus-host disease increased the risk of SNs, especially those involving the oral cavity.
- A study of 4,905 1-year survivors of allogeneic HSCT who underwent transplant between 1969 and 2014 for malignant or nonmalignant diseases, and were followed for a median 12.5 years, demonstrated a strong effect of TBI dose and dose fractionation on risk of SNs.[32]
  - The 20-year cumulative incidence of SN after HSCT for individuals treated at younger than 20 years was 8.1%.
  - SN risk was highest in survivors exposed to high-dose, single-fraction TBI (6–12 Gy) or very high-dose fractionated TBI (14.4–17.5 Gy).
  - With low-dose TBI (2–4.5 Gy), the SN risk was comparable to the risk with chemotherapy alone, although it was still twofold higher than in the general population.
  - Among individuals treated at younger than 20 years, the number of SNs was 12.5-fold higher than expected in the general population, and the excess absolute risk was 10.6 per 1,000 person-years. Survivors treated with HSCT at this young age were more likely to develop SNs than were survivors who were treated after age 50 years (HR, 2.3).

Some well-established solid SNs are described in the following sections.

#### Breast cancer

Female survivors of childhood, adolescent, and young adult cancer treated with radiation therapy to fields including the chest are at increased risk of developing breast cancer.

- The cumulative breast cancer incidence ranges from 8% to 20% by age 40 to 45 years among childhood cancer survivors and is as high as 35% by age 50 years in Hodgkin lymphoma survivors, comparable to that observed among BRCA gene variant carriers.[18,33-36]
- Radiation dose and volume of breast exposed are important factors affecting risk. Specific chemotherapeutic agents, particularly alkylating agents and anthracyclines, may affect risk as well.[33,35,37]

Evidence (excess risk of breast cancer):

1. Breast cancer is the most common therapy-related solid SN after a previous diagnosis of Hodgkin lymphoma.[18,34] The following has been observed in female survivors of childhood Hodgkin lymphoma:
  - Excess risk of breast cancer has been reported in survivors treated with high-dose, extended-volume radiation at age 30 years or younger.[38]
  - Data indicate that females treated with low-dose, involved-field radiation also exhibit excess breast cancer risk.[39]
  - Patients who received limited volume supradiaphragmatic radiation therapy (excluding the axillae) had a significantly lower risk of subsequent breast cancers than patients who received full mantle-field radiation therapy.[37]
  - For patients treated with radiation therapy to the chest before age 16 years, the cumulative incidence of breast cancer approaches 20% by age 45 years.[18]
  - The latency period after chest irradiation ranges from 8 to 10 years, and the risk of subsequent breast cancer increases in a linear fashion with radiation dose (P for trend < .001).[40]
  - Treatment with higher cumulative doses of alkylating agents and ovarian radiation of 5 Gy or higher (exposures predisposing to premature menopause) have been correlated with reductions in breast cancer risk, underscoring the potential contribution of hormonal stimulation on breast carcinogenesis.[37,41,42]
  - The observed number of invasive breast cancer cases among young (aged <30 years) survivors, compared with what is expected in the general population, has decreased over recent treatment eras (1970s SIR, 55.0 vs. 1990s SIR, 14.3).[36]
2. The risk of breast cancer was also increased in the following studies that used lower radiation doses to treat cancer that metastasized to the chest/lung (e.g., Wilms tumor, sarcoma) and exposed the breast tissue:
  a. In 116 children in the CCSS cohort treated with 2 Gy to 20 Gy to the lungs (median, 14 Gy), the SIR for breast cancer was 43.6 (95% CI, 27.1–70.1).[35]
  b. A report of 2,492 female participants in the National Wilms Tumor Studies 1 through 4 (1969–1995) addressed the excess risk of breast cancer.[43]
    - Sixteen of 369 women who received chest irradiation for metastatic Wilms tumor developed invasive breast cancer (cumulative risk at age 40 years, 14.8% [95% CI, 8.7%–24.5%]). The SIR of 27.6 (95% CI, 16.1–44.2) was based on 5,010 person-years of follow-up.
    - Of the 369 patients, radiation doses to the chest were less than 12 Gy in 4%, 12 Gy in 64%, 13 Gy to 15 Gy in 19%, and more than 15 Gy in 13% of patients.
    - For all patients who developed breast cancer (with or without chest irradiation), the median age at first breast cancer diagnosis was 34.3 years (range, 15.5–48.4) and the median time from Wilms tumor diagnosis was 27.1 years (range, 7.9–35.7).
3. An international collaborative study pooled individual patient data from 17,903 childhood cancer survivors. The study evaluated the dose-dependent effects of individual anthracycline agents on the development of subsequent breast cancer and interactions with chest radiation therapy. There were 782 survivors (4.4%) who developed a subsequent breast cancer.[44]
  - Doxorubicin was associated with a dose-dependent increase of subsequent breast cancer risk (HR per 100 mg/m^2^, 1.24; 95% CI, 1.18–1.31).
  - There was a more-than-twofold increased risk for survivors treated with 200 mg/m^2^ or higher cumulative doxorubicin dose, compared with no doxorubicin (HR, 2.50 for 200–299 mg/m^2^; HR, 2.33 for 300–399 mg/m^2^; HR, 2.78 for ≥400 mg/m^2^).
  - The associations were not statistically significant for daunorubicin, whereas epirubicin was associated with increased subsequent breast cancer risk (exposure yes vs. no: HR, 3.25; 95% CI, 1.59–6.63).
  - The HRs per 100 mg/m^2^ of doxorubicin were 1.11 (95% CI, 1.02–1.21) for patients treated with chest radiation therapy and 1.26 (95% CI, 1.17–1.36) for patients who did not receive chest radiation therapy.
4. The risk of developing breast cancer after radiation therapy and chemotherapy with anthracyclines was evaluated in the CCSS. In a nested-case control study of 271 childhood cancer survivors (diagnosed between 1970–1986) who were subsequently diagnosed with breast cancer, the combination of anthracyclines and radiation therapy to the breast was associated with increased risks of breast cancer consistent with an additive interaction.[33]
  - For the study group, the median age of first cancer diagnosis was 15 years and the median age at breast cancer diagnosis was 39 years.
  - The OR for breast cancer increased with increasing radiation dose to the breast (OR per 10 Gy, 3.9; 95% CI, 2.5–6.5) and was similar for estrogen receptor–positive and estrogen receptor–negative cancers.
  - The OR per 10 Gy to the breast was higher for women who received ovarian doses less than 1 Gy (OR, 6.8; 95% CI, 3.9–12.5) than for women who received ovarian doses greater than or equal to 15 Gy (OR, 1.4; 95% CI, 1.0–6.4).
  - The OR for breast cancer increased with cumulative anthracycline dose (OR per 100 mg/m^2^, 1.23; 95% CI, 1.09–1.39; P < .01 for trend).
  - There was an additive interaction between radiation therapy and anthracycline treatment. The OR was 19.1 (95% CI, 7.6–48.0) for the combined association of anthracycline therapy and breast radiation dose of 10 Gy or more (compared with 0 to less than 1 Gy) versus 9.6 (95% CI, 4.4–20.7) without anthracycline therapy.
5. Childhood cancer survivors not exposed to chest radiation also have an increased risk of breast cancer at a young age.
  a. The SJLIFE study assessed subsequent breast cancer risk among 1,467 female cancer survivors and evaluated risk associated with anthracycline exposure. The study also evaluated whether surveillance imaging affects breast cancer outcomes.[25]
    - In women who received neither chest radiation nor anthracyclines, the cumulative incidence of breast cancer was 2% at age 35 years and 15% at age 50 years. For women who were treated with 250 mg/m^2^ or higher of anthracyclines, the rates were 7% at age 35 years and 46% at age 50 years.
    - Anthracycline doses of 250 mg/m^2^ or higher remained significantly associated with increased risk of breast cancer in models, excluding survivors with cancer predisposition gene variants, chest radiation of 10 Gy or higher, or both.
    - Breast cancers detected by imaging and/or prophylactic mastectomy were more likely to be in situ carcinomas, be smaller masses, have no lymph node involvement, and be treated without chemotherapy, compared with breast cancers detected by physical findings.
    - Dual imaging with mammography and breast magnetic resonance imaging (MRI) in this cohort was a sensitive and specific approach to identify breast cancers that require less aggressive therapy than breast cancers detected by physical findings.
  b. A CCSS investigation examined the breast cancer risk of 3,768 female participants who did not receive chest radiation.[45]
    - A fourfold excess risk (SIR, 4.0; 95% CI, 3.0–5.3) of breast cancer was observed compared with rates in the general population.
    - Breast cancer risk was highest among survivors of sarcoma (SIR, 5.3; 95% CI, 3.6–7.8) and leukemia (SIR, 4.1; 95% CI, 2.4–6.9), for whom the cumulative incidence of breast cancer was estimated to be 5.8% and 6.3%, respectively, by age 45 years.
    - Treatment with alkylating agents and anthracyclines increased the risk of breast cancer in a dose-dependent manner.
  c. CCSS investigators also examined SN risk among 7,448 participants who were treated with chemotherapy only.[12]
    - Breast cancer incidence was 4.6-fold greater than what would be expected in the general population (SIR, 4.6; 95% CI, 3.5–6.0).
    - A linear dose response was demonstrated between anthracyclines and breast cancer rate (RR, 1.3/100 mg/m^2^; 95% CI, 1.2–1.6).
  d. DCOG-LATER investigators evaluated the contribution of chemotherapy to solid cancer risk in a large cohort of childhood cancer survivors diagnosed between 1963 and 2001.[13]
    - Survivors treated with doxorubicin exhibited a dose-dependent increased risk of breast cancer (HR, 3.1; 95% CI, 1.4–6.5 among survivors treated with anthracycline doses of 250 mg/m^2^ or higher).
    - The doxorubicin–breast cancer dose response was stronger for survivors of Li-Fraumeni–associated cancers (leukemia, CNS, and sarcomas other than Ewing) than for survivors of other cancers.
6. A SEER Program–based study evaluated trends in surgical management and the 5- and 10-year cumulative incidence of contralateral breast cancer among women who were treated with radiation therapy for Hodgkin lymphoma before age 30 years and diagnosed with a subsequent breast cancer between 1990 and 2016.[46]
  - Overall, 263 (89.2%) women presented with unilateral breast cancer, 50 of whom (19.0%) underwent breast-conserving surgery and 213 of whom (81.0%) underwent mastectomy (40.5% bilateral).
  - The 5-year incidence of contralateral breast cancer in women who underwent unilateral surgery was 9.4% (95% CI, 5.6%–15.4%), increasing to 20.2% (95% CI, 13.7%–29.2%) at 10 years and 29.9% (95% CI, 20.8%–41.9%) at 15 years. This finding underscores the importance of ongoing breast cancer surveillance and consideration of prophylactic mastectomy.

Breast cancer risk varies among childhood cancer survivors who are treated with chest radiation therapy, and the risk is based on multiple clinical factors. The first personalized breast cancer risk prediction model was developed and validated using multinational cohorts of female 5-year cancer survivors who were diagnosed at younger than 21 years and treated with chest irradiation (n = 2,147). The model includes current age, chest radiation field, whether chest radiation was delivered within 1 year of menarche, anthracycline exposure, age of menopause, and history of a first-degree relative with breast cancer. The model is available as an online risk calculator (https://ccss.stjude.org/tools-documents/calculators-other-tools/breast-cancer-probability-calculator.html).[47]

##### Subsequent versus de novo breast cancer

Several studies have investigated the clinical characteristics of subsequent breast cancers arising in women treated with radiation therapy for childhood cancer.[48-52]

- In one population-based study, radiation-induced breast cancer was noted to have more adverse clinicopathological features, as evidenced by a twofold increased risk of estrogen receptor–negative, progesterone receptor–negative breast cancer observed among 15-year Hodgkin lymphoma survivors, compared with women who had sporadic breast cancer.[48]
- Other studies have observed a higher proportion of more histologically aggressive subtypes (e.g., triple-negative breast cancer) than age-matched sporadic invasive cancers.[49,50]
- These findings are in contrast to other smaller, hospital-based, case-control studies of breast cancer among Hodgkin lymphoma survivors that have not identified a significant variation in hormone receptor status when compared with primary breast cancer controls. Previous studies have also not demonstrated a significant difference in overall risk of high-grade versus low-grade tumors.[51,52]
- A study using SEER Program data evaluated the clinicopathological features of 321 breast cancers diagnosed in 257 women (median age, 22 years; range, 18–26 years at Hodgkin lymphoma diagnosis) who were previously treated with radiation for Hodgkin lymphoma.[53]
  - Women who developed breast cancer after radiation for Hodgkin lymphoma were younger than women diagnosed with breast cancer without a prior malignancy (43 vs. 60 years) and were less likely to present with ductal carcinoma in situ (0.4% vs. 14.9%).
  - Radiation was not associated with poorer biological features, compared with breast cancers diagnosed in similarly aged women with no prior malignancy. However, higher proportions of upper outer quadrant and smaller tumors (≤2 cm) were found.
  - Most tumors in survivors of Hodgkin lymphoma were hormone sensitive (nearly two-thirds were estrogen receptor–positive/HER2-negative). This finding suggests that endocrine prevention may be an option for this high-risk population.

##### Mortality after subsequent breast cancer

In a study of female participants in the CCSS who were subsequently diagnosed with breast cancer (n = 274) and matched to a control group of women (n = 1,095) with de novo breast cancer, the following was observed:[54]

- Survivors of childhood cancer were found to have elevated mortality rates (HR, 2.2; 95% CI, 1.7–3.0), even after adjusting for breast cancer treatment.
- Survivors were five times more likely to die from other health-related causes, including other SMNs and cardiovascular or pulmonary disease (HR, 5.5; 95% CI, 3.4–9.0).
- The cumulative incidence of a second asynchronous breast cancer was elevated significantly compared with controls (at 5 years, 8.0% among childhood cancer survivors vs. 2.7% among controls; P < .001).

Although current evidence does not show a survival benefit from the initiation of breast cancer surveillance in women treated with radiation therapy to the chest for childhood cancer, interventions to promote detection of small and early-stage tumors may improve prognosis. Those with more limited treatment options because of previous exposure to radiation or anthracyclines may especially benefit.

In support of surveillance, SJLIFE investigators observed that breast cancers detected by imaging and/or prophylactic mastectomy were more likely to be in situ carcinomas, be smaller masses (3.3 cm mean tumor size detected by physical examination vs. 1.1 cm detected by imaging), have no lymph node involvement, and be treated without chemotherapy, compared with breast cancers detected by physical findings.[25]

Investigators used data from the CCSS and two Cancer Intervention and Surveillance Modeling Network breast cancer simulation models to estimate the clinical benefits, harms, and cost-effectiveness of breast cancer screening among childhood cancer survivors who were previously treated with chest radiation.[55]

- Screening with mammography and MRI, as recommended in COG Long-Term Follow-Up guidelines, is projected to avert half of the expected breast cancer deaths among high-risk survivors.
- On an annual schedule, a survivor will have an average of 4 to 5 false-positive screening results and 1 to 2 benign biopsy results over the course of their lifetime.
- Because of the large survival benefits, the harm-benefit tradeoffs for survivors were found to be appropriate, resulting in more favorable harm-benefit ratios.

Another CCSS investigation quantified the association between temporal changes in cancer treatment over three decades and subsequent breast cancer risk.[36]

- The cumulative incidence of breast cancer was 8.1% (95% CI, 7.3%–9.0%) by age 45 years among 11,550 female survivors (median age, 34.2 years), representing a more than sixfold excess risk (SIR, 6.6; 95% CI, 6.1–7.2), compared with age-, sex-, and calendar year–matched controls.
- Concurrent with changes in therapy by decade, including reduced rates of chest and pelvic radiation therapy and increased rates of anthracycline chemotherapy exposure, and adjusting for age and age at diagnosis, the invasive breast cancer rate decreased 18% for every 5 years of primary cancer diagnosis era (rate ratio, 0.82; 95% CI, 0.74–0.90). This finding was largely associated with the reduced rate of chest radiation therapy.

#### Thyroid cancer

Thyroid cancer is observed after the following:[12,24,56,57]

- Neck radiation therapy for Hodgkin lymphoma, acute lymphoblastic leukemia (ALL), and brain tumors.
- Iodine I 131-metaiodobenzylguanidine (131I-MIBG) treatment for neuroblastoma.
- TBI for HSCT.
- Chemotherapy only, without therapeutic radiation.

The 25-year cumulative incidence of thyroid cancer among survivors of childhood cancer is 0.5%.[13] The risk of thyroid cancer among childhood cancer survivors is more than tenfold higher than that of the general population (SIR, 10.5; 95% CI, 9.1–12).[4] Significant modifiers of the radiation-related risk of thyroid cancer include the following:[28,58]

- Female sex.
- Younger age at exposure.
- Longer time since exposure.
- Radiation dose. A linear dose-response relationship between radiation exposure and thyroid cancer is observed up to 10 Gy, with a leveling off between 10 Gy and 30 Gy, and a decline in the OR at higher doses, especially in children younger than 10 years at treatment, suggesting a cell killing effect of the target cells at higher doses.[24,28,59]

In a Dutch case-control study, childhood cancer survivors with subsequent thyroid cancer were more likely to present with smaller tumors and bilateral tumors than the general population. Treatment outcomes were similar between subsequent and sporadic thyroid cancers.[60]

For information about detecting thyroid nodules and thyroid cancer, see the Thyroid nodules section.

#### CNS tumors

Subsequent CNS tumors represent a spectrum of histological subtypes, from high-grade gliomas to benign meningiomas. A comprehensive Pediatric Normal Tissue Effects in the Clinic (PENTEC) review analyzed the risk of SNs. The study reported a 10-year median latency period for the development of a malignant CNS neoplasm and a 21-year median latency period for the development of a meningioma.[61] Accurate assessment of the prevalence of low-grade and benign lesions is challenging because of the variable opinions and practices related to neuroimaging versus symptom surveillance in long-term survivors treated with cranial irradiation. Therefore, the prevalence of these tumors is likely higher than proven.

Brain tumors develop after cranial irradiation for histologically distinct brain tumors or for management of disease among ALL or non-Hodgkin lymphoma patients.[62] SIRs reported for subsequent CNS neoplasms after treatment for childhood cancer range from 8.1 to 52.3 across studies.[24]

The risk of subsequent brain tumors demonstrates a linear relationship with radiation dose.[26,61,63]

- The risk of meningioma after radiation increases with radiation dose,[9,61] and in some studies is further potentiated with increased exposure to intrathecal methotrexate.[26] However, this finding has not been consistently replicated.[10]
- Cavernomas have also been reported with considerable frequency after CNS irradiation but have been speculated to result from angiogenic processes as opposed to true tumorigenesis.[64-66]

The Dutch Long-Term Effects after Childhood Cancer (LATER) investigators have described the clinical characteristics of childhood cancer survivors who developed histologically confirmed meningiomas.[11]

- In 6,015 childhood cancer survivors from the LATER cohort, 1,551 of whom had prior cranial radiation therapy, 93 survivors developed meningiomas.
- Of these patients, 89 (95.7%) were treated with prior cranial radiation therapy. The median age at diagnosis was 31.8 years (range, 13.2–50.5 years).
- Thirty of the survivors presented with synchronous meningiomas, and 84 survivors presented with symptoms. Only 16% of the meningiomas were detected in late effects clinics.
- All survivors underwent surgery, and one-third (n = 31) of them also received radiation therapy. Twelve survivors had three or more surgeries for growth of residual tumor, recurrences, and new meningiomas. Although the extent of surgical resection was not described, the indications for radiation therapy during follow-up after surgical resection included residual tumor, recurrences, location, or new meningioma. During follow-up, 38 survivors (40.9%) developed new meningiomas, 22 (23.7%) had recurrences, and at least 4 died because of the meningioma.

The European PanCare Childhood and Adolescent Cancer Survivor Care and Follow-Up Studies (PanCareSurFup) investigators described findings in childhood cancer survivors who developed meningiomas or gliomas:[67]

- In 69,460 survivors, 279 developed gliomas, and 761 developed meningiomas.
- Gliomas and meningiomas were most frequently observed after any CNS tumor or leukemia, accounting for more than 70% of all observed gliomas and 80% of all meningiomas.
- Among patients with known cranial radiation status who developed a glioma, 61% had received prior cranial radiation therapy. Among patients who developed a meningioma, 64.7% had received cranial radiation therapy.
- CNS tumor survivors treated with cranial radiation therapy were at the highest risk of developing gliomas, at 27 times the risk of the general population (95% CI, 21.5–33.2). CNS tumor survivors who did not receive cranial radiation were at 8.3 times the risk of the general population (95% CI, 4.9–14.1).
- Among CNS tumor survivors, the relative risk for patients who received cranial radiation therapy was 13 times the risk for patients who did not receive cranial radiation therapy (95% CI, 6.7–25.4). Among leukemia survivors, those who received cranial radiation therapy were at a 5-fold increased risk compared with those treated without cranial radiation therapy (95% CI, 2.9–9.9).

A PENTEC analysis of CNS SNs included 32 published studies of 1,035 subsequent meningiomas after previous radiation therapy in childhood cancer survivors.[61]

- A significant dose-response relationship was reported for CNS subsequent meningiomas (excess relative ratio [ERR]/Gy, 0.44).
- Younger age at the time of primary diagnosis was associated with a higher risk of subsequent meningiomas.
- Females had a higher risk of subsequent meningiomas than males (odds ratio, 1.46; P < .0001).
- Median latency time to the development of meningiomas was 21 years.

Neurological sequelae associated with meningiomas can include seizures, auditory-vestibular-visual deficits, focal neurological dysfunction, and severe headaches.[9] Despite the well-established increased risk of subsequent CNS neoplasms among childhood cancer survivors treated with cranial irradiation and the growing recognition of associated morbidity, the current literature is insufficient to evaluate the potential harms and benefits of routine screening for these lesions.[68] The decision to initiate surveillance should be shared by the cancer survivor and health care provider after carefully considering the potential harms and benefits of surveillance for CNS neoplasms, such as meningioma.

Proton radiation therapy for pediatric medulloblastoma is associated with low rates of brain stem injury and secondary malignancies. The long-term effects were reported in 178 pediatric patients with medulloblastoma who were treated with surgery, proton radiation therapy, and chemotherapy between 2002 and 2016 (median follow-up, 9.3 years).[69]

- At 10 years, eight patients (4.5%) developed a secondary tumor (benign or malignant), with median follow up of 9.1 years. Three patients (1.7%) developed a secondary malignancy.
- In-field second malignancies were glioblastoma (n = 2), meningioma (n = 2), and high-grade glioma (n = 1). The other malignancies were one each of ovarian fibroma, plexiform fibromyxoma of the esophagus, and papillary thyroid carcinoma.
- Four patients developed brain stem injury at a median of 4.2 years. The 5-year cumulative incidence of brain stem injury was 1.1%, and the 10-year cumulative incidence was 1.9%.

#### Bone and soft tissue tumors

Survivors of hereditary retinoblastoma, Ewing sarcoma, and other malignant bone tumors are at a particularly increased risk of developing subsequent bone and soft tissue tumors.[70-74]

- Radiation therapy is associated with a linear dose-response relationship.[75,76]
- In a PENTEC investigation on subsequent malignancies, the estimated pooled ERR/Gy for subsequent sarcomas was 0.045. There was a possible biphasic dose response, with higher rates of relapse and subsequent sarcomas above 55 Gy. After 20 Gy and anthracyclines, the absolute excess risk is predicted to be 0.24% at 50 years and 0.86% at 75 years. The median latency time to the development of sarcomas was 11 years (range, 4–23 years).[61]
- After adjustment for radiation therapy, treatment with alkylating agents [13,61] and anthracyclines [77] have both been linked to sarcoma, with the risk increasing with cumulative drug exposure.[77]
- Soft tissue sarcomas can be of various histological subtypes, including nonrhabdomyosarcoma soft tissue sarcomas, rhabdomyosarcoma, malignant peripheral nerve sheath tumors, Ewing/primitive neuroectodermal tumors, and other rare tumor types.

Evidence (excess risk of bone and soft tissue tumors):

1. A nested case-control study included 228 cases and 228 matched controls within a cohort of 69,460 5-year survivors of childhood cancer. The study investigated the risks of subsequent primary bone cancer by different levels of cumulative radiation exposure and dose-response relationships according to different specific types of chemotherapy.[78]
  - Compared with unexposed bone tissue, the OR associated with bone tissue exposed to 1 to 4 Gy was 4.8-fold (95% CI, 1.2–19.6). The OR associated with bone tissue exposed to 5 to 9 Gy was 9.6-fold (95% CI, 2.4–37.4). The OR increased linearly with increasing doses of radiation (P_trend_ < .001), up to 78-fold (95% CI, 9.2–669.9) for doses of 40 Gy or higher.
  - For cumulative alkylating agent doses of 10,000 to 19,999 mg/m^2^ and 20,000 mg/m^2^ or higher, the radiation-adjusted ORs were 7.1 (95% CI, 2.2–22.8) and 8.3 (95% CI, 2.8–24.4), respectively. There were independent contributions from exposure to procarbazine, ifosfamide, or cyclophosphamide.
2. A population-based study of 69,460 5-year survivors of cancer diagnosed before age 20 years observed the following:[71,72]
  - The risk of subsequent primary bone cancer was 22-fold greater than that of the general population, with an estimated 45-year cumulative incidence of 0.6%, compared with an expected rate of 0.03% in the general population.[71]
  - The observed excess numbers of subsequent primary bone cancer declined with both age and years from diagnosis.[71]
  - The risk of subsequent soft tissue sarcoma was almost 16-fold higher than the general population, with an estimated 45-year cumulative incidence of 1.4%, compared with an expected rate of 0.1%.[72]
  - The median time from diagnosis to occurrence of a soft tissue sarcoma was 19 years.[72]
  - The most commonly observed soft tissue sarcomas were leiomyosarcoma, fibromatous neoplasms, and malignant peripheral nerve sheath tumors.[72]
  - The SIR for subsequent fibromatous primary sarcomas decreased with increasing years from diagnosis and attained age, whereas the SIR for leiomyosarcoma and malignant peripheral nerve sheath tumors remained consistently high across all years from diagnosis and at all attained ages.[72]
  - The absolute excess risks of all sarcoma subtypes were generally low, except for leiomyosarcoma that followed a retinoblastoma diagnosis (absolute excess risks, 52.7 per 10,000 person-years among survivors 45 years or more from diagnosis).[72]
  - The risk of developing a leiomyosarcoma was 30-fold higher among survivors of childhood cancer, compared with an excess risk of 0.7 for the general population.[72]
    - Retinoblastoma survivors were at the highest risk (SIR, 342.9), followed by Wilms tumor survivors (SIR, 74.2).
    - 90% of leiomyosarcomas observed after a Wilms tumor diagnosis developed within the irradiated tissue.
3. In a CCSS cohort, an increased risk of subsequent bone or soft tissue sarcoma was associated with radiation therapy, a primary diagnosis of sarcoma, a history of other SNs, and treatment with higher doses of anthracyclines or alkylating agents.[27]
  - The 30-year cumulative incidence of subsequent sarcoma in CCSS participants was 1.08% for survivors who received radiation therapy and 0.5% for survivors who did not receive radiation therapy.
4. Dose-risk modeling was used to study the risk of bone sarcoma in a retrospective cohort of 4,171 survivors of a childhood solid cancer treated between 1942 and 1986 (median follow-up, 26 years).[75]
  - Results demonstrated that the risk of bone sarcoma increased slightly up to a cumulative organ-absorbed radiation dose of 15 Gy (HR, 8.2; 95% CI, 1.6–42.9) and then rapidly increased for higher radiation doses (HR for 30 Gy or more, 117.9; 95% CI, 36.5–380.6), compared with patients not treated with radiation therapy.
  - The excess RR per Gy in this model was 1.77 (95% CI, 0.62–5.94).
5. In survivors of bilateral retinoblastoma, the most commonly observed malignant SN is sarcoma, specifically osteosarcoma.[79-81] The contribution of chemotherapy to solid malignancy carcinogenesis was highlighted in a long-term follow-up study of 906 5-year hereditary retinoblastoma survivors who were diagnosed between 1914 and 1996 and observed through 2009.[70]
  - Treatment with alkylating agents significantly increased risk of subsequent bone tumors (HR, 1.60; 95% CI, 1.03–2.49) and leiomyosarcoma (HR, 2.67; 95% CI, 1.22–5.85) among members of the cohort.
  - Leiomyosarcoma occurrence was more common after treatment with alkylating agent chemotherapy and radiation therapy compared with radiation therapy alone (5.8% vs. 1.6% at age 40 years; P = .01).
6. The CCSS reported the following on 105 cases and 422 matched controls in a nested case-control study of 14,372 childhood cancer survivors:[77]
  - Soft tissue sarcomas occurred at a median of 11.8 years (range, 5.3–31.3 years) from original diagnoses.
  - Any exposure to radiation was associated with increased risk of soft tissue sarcoma (OR, 4.1; 95% CI, 1.8–9.5), which demonstrated a linear dose-response relationship.
  - Anthracycline exposure was associated with soft tissue sarcoma risk (OR, 3.5; 95% CI, 1.6–7.7), independent of radiation dose.
7. In a cohort of 952 irradiated survivors of hereditary retinoblastoma diagnosed between 1914 and 2006, CCSS investigators observed that elevated bone and soft tissue sarcoma risks differed by age, location, and sex.[81]
  - Head and neck bone and soft tissue sarcomas were diagnosed beginning in early childhood and continued well into adulthood (60-year cumulative incidence of 6.8% and 9.3%, respectively).
  - Body and extremity bone sarcoma incidence flattened after adolescence (60-year cumulative incidence, 3.5%).
  - Body and extremity soft tissue sarcoma incidence was rare until age 30 years, when incidence rose steeply (60-year cumulative incidence, 6.6%) particularly for females (60-year cumulative incidence, 9.4%).
8. In a retrospective study of 160 patients with hereditary retinoblastoma who received radiation therapy, no correlation was identified between age (before or after 12 months) at which external-beam radiation therapy was given and development of subsequent malignancy.[73]
  - Patients with and without subsequent malignancies did not differ by RB1 variant type. Also, there was no association with variant type and location of SMN, or SMN type and age at diagnosis.
  - The study showed that patients who have a low penetrance variant and receive external-beam radiation therapy remain at risk of SMNs and should be cautiously monitored.

#### Skin cancer

Keratinocyte carcinomas (KCs) (i.e., basal cell carcinomas [BCCs] and squamous cell carcinomas [SCCs], also called nonmelanoma skin cancers [NMSCs]) are one of the most common SNs among childhood cancer survivors and show a strong association with radiation therapy.[4,82,83] Adherence to sun protection behaviors can reduce exposure to UV radiation that may exacerbate risk.

The CCSS performed a randomized, controlled, comparative effectiveness trial to test methods to improve early detection of skin cancer among survivors of childhood cancer at high risk after radiation therapy exposure. Participants were randomly assigned to the experimental arm, which included print materials in combination with mHealth strategies (text messages and use of the Advancing Survivors’ Knowledge website), or the control arm. Screening rates improved by 1.5-fold in the experimental arm. Rates of physician skin examination increased from baseline to 12 months, and rates of self-examination increased from baseline to 18 months in all three intervention groups. However, the increase in rates did not differ between the intervention groups.[84]

Evidence (excess risk of KCs):

1. An updated analysis of the CCSS confirmed an increased risk of KCs in participants with histories of radiation therapy. Compared with participants who did not receive radiation therapy, CCSS participants treated with radiation therapy had a 4.5-fold increased risk of KCs (95% CI, 3.5–5.9).[83]
  - The risk of KCs increased with higher radiation therapy doses. Per 10 Gy of radiation therapy at the KC site, the RR was similar for head/neck (1.0; 95% CI, 1.0–1.1) and extremity sites (1.0; 95% CI, 0.7–1.3). The RR was slightly higher for trunk sites (1.1; 95% CI, 1.0–1.3).
  - Allogeneic and autologous HSCT were associated with an increased risk of KCs (RR for allogeneic HSCT, 3.4; 95% CI, 2.4–4.8 and RR for autologous HSCT, 2.3; 95% CI, 1.2–4.2).
2. In 5,843 childhood cancer survivors in the DCOG-LATER cohort, investigators found that childhood cancer survivors had a 30-fold increased risk of developing BCCs.[30]
  - After a first BCC diagnosis, 46.7% of patients developed additional BCCs.
  - BCC risk was associated with any radiation therapy to the relevant radiation field (site of BCC) (HR, 14.32) and with estimated percentage of exposed skin surface area (26%–75%: HR, 1.99; 76%–100%: HR, 2.16 vs. 1%–25% exposed; P_trend_ among exposed = .002).
  - BCC risk was not associated with prescribed radiation dose and likelihood of sun-exposed skin area.
  - Of all chemotherapy groups examined, only vinca alkaloids increased the BCC risk (HR, 1.54).
3. The occurrence of a KC as the first SN has been reported to identify a population at high risk of a future invasive malignant SN.[7]
  - CCSS investigators observed a cumulative incidence of a malignant neoplasm of 20.3% (95% CI, 13.0%–27.6%) at 15 years among radiation-exposed survivors who developed a KC as a first SN, compared with 10.7% (95% CI, 7.2%–14.2%) among survivors whose first SN was an invasive malignancy.

Malignant melanoma has also been reported as an SN in childhood cancer survivor cohorts, although at a much lower incidence than NMSCs.

Risk factors for malignant melanoma identified among these studies include the following:[85]

- Radiation therapy (>40 Gy).
- Alkylating agents.
- Bleomycin.

Evidence (excess risk of melanoma):

1. Investigators assessed the incidence, risk factors, and outcomes for patients with melanoma in the CCSS cohort (n = 25,716).[85]
  - There were 160 survivors (median attained age, 33 years) who developed 177 melanomas (110 invasive, 62 in situ cutaneous, 5 ocular).
  - The 40-year cumulative incidence was 1.1% for all participants and 1.5% for those who received cumulative radiation doses of 40 Gy or higher. The standard incidence ratios were 2.0 when compared with the general population.
  - An increase in cutaneous melanomas was associated with a cumulative radiation dose of 40 Gy or higher to the site of the melanoma (HR, 2.0), cumulative cyclophosphamide equivalent dose of 20,000 mg/m^2^ or higher (HR, 1.9), and bleomycin exposure (HR, 2.2).
  - The presence of an invasive melanoma was associated with a twofold risk of death.
2. A systematic review that included data from 19 original studies (total N = 151,575 survivors; median follow-up of 13 years) observed an incidence of 10.8 cases of malignant melanoma per 100,000 childhood cancer survivors per year.[86]
  - Melanomas most frequently developed in survivors of Hodgkin lymphoma, hereditary retinoblastoma, soft tissue sarcoma, and gonadal tumors. However, the relatively small number of survivors represented in the relevant studies preclude assessment of melanoma risk among other types of childhood cancer.

##### Skin cancer risk after retinoblastoma

The incidence of melanoma and NMSC was evaluated in a cohort of 1,851 long-term, White survivors of retinoblastoma (1,020 hereditary and 831 nonhereditary) who were diagnosed from 1914 to 2006 and monitored through 2016.[87]

- Of all patients, 33 hereditary and 7 nonhereditary survivors developed melanoma, and 26 hereditary and 9 nonhereditary survivors developed NMSC. The median age of skin cancer development was about 20 years younger for hereditary survivors than nonhereditary survivors.
- Most NMSCs were on the head/neck, whereas melanomas were more broadly distributed, with patterns similar to melanoma-prone families.
- At 50 years after retinoblastoma diagnosis, in hereditary survivors, the cumulative incidence of melanoma was 4.5% and the cumulative incidence of NMSC was 3.7%. In nonhereditary survivors, the cumulative incidence of melanoma was 0.7% and the cumulative incidence of NMSC was 1.5%.

#### Lung cancer

Among childhood cancer survivor cohorts, lung cancer represents a relatively uncommon SN. A PENTEC systematic review reported a median latency period of 25 years (range, 19–29 years) between the childhood cancer diagnosis and the development of a lung SN.[61] The ERR/Gy was 0.068, compared with background cumulative risks. After 20 Gy, the excess absolute risk was predicted to be 0.27% at 50 years. After 50 Gy, the excess absolute risk was predicted to be 0.7% at 50 years.[61]

Evidence (excess risk of lung cancer):

1. The 30-year cumulative incidence of lung cancer among CCSS participants was 0.16% (95% CI, 0.09%–0.23%), representing a SIR of 4.0 (95% CI, 2.9–5.4).[88]
  - Lung cancer risk demonstrated a dose-related association with chest radiation dose: 10 to 30 Gy (HR, 3.4; 95% CI, 1.05–11.0), more than 30 to 40 Gy (HR, 4.6; 95% CI, 1.5–14.3), and more than 40 Gy (HR, 9.1; 95% CI, 3.1–27.0).
  - Cumulative incidence of lung SMNs was higher among current or past smokers, compared with those who had never smoked.
  - The SIR for lung cancer was highest among survivors of Hodgkin lymphoma (SIR, 9.3; 95% CI, 6.2–13.4) and bone cancer (SIR, 4.4; 95% CI, 1.8–9.1).
2. The 25-year cumulative incidence of lung cancer among the DCOG-LATER cohort was 0.1% (95% CI, 0.0%–0.3%).[13]
  - Incidence was approximately fourfold higher than what would be expected in the general population (SIR, 4.3; 95% CI, 1.9–8.5).
3. Lung cancer has been reported after chest irradiation for Hodgkin lymphoma.[89]
  - The risk increases in association with longer elapsed time from diagnosis.
4. Smoking has been linked with the occurrence of lung cancer that develops after radiation therapy for Hodgkin lymphoma.[89]
  - The increase in risk of lung cancer with increasing radiation dose is greater among patients who smoke after exposure to radiation than among those who refrain from smoking (P = .04).

#### Gastrointestinal (GI) cancer

There is substantial evidence that childhood cancer survivors develop GI malignancies more frequently and at a younger age than the general population. This evidence supports the need for early initiation of colorectal carcinoma surveillance.[90-92]

Evidence (excess risk of GI cancer):

1. In a French and British cohort-nested, case-control study of childhood solid tumor survivors diagnosed before age 17 years, the risk of developing a digestive organ SN varied with therapy.[93]
  - The risk of GI cancer was 9.7-fold higher than in population controls.
  - The SNs most often involved the colon/rectum (42%), liver (24%), and stomach (19%).
  - A strong radiation dose-response relationship was observed, with an OR of 5.2 (95% CI, 1.7–16.0) for local radiation doses between 10 Gy to 29 Gy and 9.6 (95% CI, 2.6–35.2) for doses of 30 Gy and above, compared with survivors who had not received radiation therapy.
  - Chemotherapy alone and combined-modality therapy were associated with a significantly increased risk of developing a GI SN (SIR, 9.1; 95% CI, 2.3–23.6; SIR 29.0; 95% CI, 20.5–39.8, respectively).
2. The PanCare Childhood and Adolescent Cancer Survivor Care and Follow-Up Studies (PanCareSurFup) consortium quantified the absolute risks by radiation therapy treatment characteristics in a cohort of 69,450 5-year childhood cancer survivors in Europe. ORs were calculated from a case-control study comprising 143 subsequent colorectal cancers within the cohort of childhood cancer survivors.[92]
  - Survivors treated with any abdominopelvic radiation therapy were three times more likely to develop a subsequent colorectal cancer than those who did not receive radiation therapy (OR, 3.1; 95% CI, 1.4–6.6).
  - By age 40 years, survivors who were treated with abdominopelvic radiation therapy already have a similar risk of colorectal cancer as individuals aged 50 years in the general population when population-based colorectal cancer screening begins.
  - The risk of colorectal cancer increases with abdominopelvic radiation therapy dose. Survivors treated with spinal or whole-abdomen radiation therapy are at higher risk than those treated with radiation to other abdominopelvic fields.
3. CCSS investigators reported a 4.6-fold higher risk of GI SNs among their study participants than in the general population (95% CI, 3.4–6.1).[90]
  - The SNs most often involved the colon (39%), rectum/anus (16%), liver (18%), and stomach (13%).
  - The SIR for colorectal cancer was 4.2 (CI, 2.8–6.3).
  - The most prevalent GI SN histology was adenocarcinoma (56%).
  - The highest risk of GI SNs was associated with abdominal irradiation (SIR, 11.2; CI, 7.6–16.4), but survivors not exposed to radiation also had a significantly increased risk (SIR, 2.4; CI, 1.4–3.9).
  - High-dose procarbazine (RR, 3.2; CI, 1.1–9.4) and platinum drugs (RR, 7.6; CI, 2.3–25.5) independently increased the risk of GI SNs.
4. St. Jude Children's Research Hospital investigators observed that the SIR for subsequent colorectal carcinoma was 10.9 (95% CI, 6.6–17.0) compared with U.S. population controls. Investigators also observed the following:[91]
  - Incidence of a subsequent colorectal carcinoma increased steeply with advancing attained age, with a 40-year cumulative incidence of 1.4% ± 0.53% among the entire cohort (N = 13,048) and 2.3% ± 0.83% for 5-year survivors.
  - Colorectal carcinoma risk increased by 70% with each 10 Gy increase in radiation dose. Increasing radiation volume also increased the risk.
  - Treatment with alkylating agent chemotherapy was also associated with an 8.8-fold excess risk of subsequent colorectal carcinoma.
5. A multi-institutional prospective study observed that potentially precancerous neoplastic polyps were found in 27.8% of childhood cancer survivors who received radiation to the abdomen/pelvis at least 10 years earlier and who had colonoscopic screening between age 35 and 49 years.[94]
  - This polyp prevalence is at least as high as that previously reported for the average-risk population older than 50 years and is similar to the 24% incidence rate for patients with hereditary nonpolyposis colon cancer. Polyp prevalence rates in the general population for people aged 35 to 49 years are unclear.
6. A DCOG-LATER record linkage study evaluated the risk of histologically confirmed colorectal adenomas among 5,843 5-year childhood cancer survivors followed for a median of 24.9 years.[95]
  - The cumulative incidence of colorectal adenoma by age 45 years was 3.6% among survivors who received abdominal pelvic radiation versus 2.0% for survivors who did not receive abdominal pelvic radiation, versus 1.0% among siblings.
  - Factors associated with adenoma risk were abdominal pelvic radiation (HR, 2.1), TBI (HR, 10.6), cisplatin (HR, 2.1 for <480 mg/m^2^; HR, 3.8 for ≥480 mg/m^2^), diagnosis of hepatoblastoma (HR, 27.1), and family history of early-onset colorectal cancer (HR, 20.5).
  - Procarbazine exposure was also associated with an increased risk among survivors not exposed to abdominal pelvic radiation or TBI (HR, 2.7).
7. The PanCareSurFup consortium reported on digestive cancers in a cohort of 69,460 5-year childhood cancer survivors in Europe.[96]
  - Survivors of Wilms tumor (SIR, 12.1; 95% CI, 9.6–15.1) and Hodgkin lymphoma (SIR, 7.3; 95% CI, 5.9–9.0) were at the highest risk for GI SMNs.
  - By age 55 years, 2.3% of survivors of Wilms tumor and Hodgkin lymphoma developed a secondary colorectal cancer, a rate that is comparable to that of the general population with two or more first-degree relatives affected by GI cancer.
8. A nested case-control study examined the rate of colorectal cancer according to large bowel radiation therapy dose and procarbazine dose among 5-year Hodgkin lymphoma survivors who were diagnosed between age 15 and 50 years (only 27% of cases were 15 to 24 years old) at five hospital centers in the Netherlands (diagnosed between 1964 to 2000; median follow-up, 26 years).[97]
  - The median interval between Hodgkin lymphoma diagnosis and subsequent colorectal cancer was 25.7 years (range, 18.2–31.6 years).
  - Treatment with subdiaphragmatic radiation therapy (RR, 2.4; 95% CI, 1.4–4.1) and more than 8.4 g/m^2^ of procarbazine (RR, 2.5; 95% CI, 1.3–5.0) were associated with increased rates of colorectal cancer on univariable analysis.
  - Colorectal cancer rate increased linearly with mean radiation therapy dose to the whole large bowel and dose to the affected bowel segment. The dose response became steeper with higher doses of procarbazine and increased 1.2-fold (95% CI, 1.1–1.3) for each 1 g/m^2^ increase in procarbazine.

#### Oral cancers

The PanCareSurFup consortium reported on risks of oral second primary neoplasms (validated through pathology reports) in a cohort of 69,460 5-year childhood cancer survivors in Europe.[98]

- Oral second primary neoplasms (n = 145; 64 salivary gland, 38 tongue, 20 pharynx, 2 lip, and 21 other) developed in 143 survivors at a median age of 32 years. This represents a fivefold excess risk compared with that expected in the general population.
- Childhood cancer diagnostic groups at greatest risk for an oral second primary neoplasm included leukemia (SIR, 19.2; 95% CI, 14.6–25.2), bone sarcoma (SIR, 6.4; 95% CI, 3.7–11.0), Hodgkin lymphoma (SIR, 6.2; 95% CI, 3.9–9.9), and soft tissue sarcoma (SIR, 5.0; 95% CI, 3.0–8.5).
- Observed specific treatment associations with oral second primary neoplasms included radiation therapy and salivary gland neoplasms (SIR, 33; 95% CI, 25.3–44.5) and chemotherapy (any exposure) and tongue neoplasms (SIR, 15.9; 95% CI, 10.6–23.7).
- Data were not available to assess the contributions of health behaviors (smoking, alcohol intake) and human papillomavirus (HPV) infection status to the development of oral second primary neoplasms.

#### Urogenital cancers

Development of subsequent primary urogenital cancers in childhood and adolescent cancer survivors is rare.

Using SEER data of 43,991 patients (aged <20 years) diagnosed with a first primary cancer from 1975 to 2016, the risk of urinary system cancer was higher for both females (SIR, 5.18; 95% CI, 3.65–7.14) and males (SIR, 2.80; 95% CI, 1.94–3.92), compared with the general population.[99]

- Females were more likely than males to develop a subsequent urinary system cancer (SIR, 1.86; 95% CI, 1.13–3.03) and kidney cancer (SIR, 1.97; 95% CI, 1.11–3.53).
- Females with any first cancer had higher risks than the general population for developing cancers of the corpus uteri (SIR, 2.32; 95% CI, 1.49–3.45) and vulva (SIR, 4.27; 95% CI, 1.38–9.95).

#### Renal carcinoma

Consistent with reports among survivors of adult-onset cancer, an increased risk of renal carcinoma has been observed in survivors of childhood cancer.[29,100,101] Underlying genetic predisposition may also play a role in the risk of developing renal carcinomas because rare cases of renal carcinoma have been observed in children with tuberous sclerosis.[100] Cases of secondary renal carcinoma associated with Xp11.2 translocations and TFE3 gene fusions have also been reported and suggest that cytotoxic chemotherapy may contribute to renal carcinogenesis.[102-104]

Evidence (excess risk of renal carcinoma):

1. CCSS investigators reported a significant excess of subsequent renal carcinoma among 14,358 5-year survivors in the cohort (SIR, 8.0; 95% CI, 5.2–11.7) compared with the general population.[100]
  a. The reported overall absolute excess risk of 8.4 per 10^5^ person-years indicates that these cases are relatively rare. Highest risk was observed among the following:
    - Neuroblastoma survivors (SIR, 85.8; 95% CI, 38.4–175.2).[100] Radiation has been hypothesized to predispose children with high-risk neuroblastoma to renal carcinoma.[105]
    - Those treated with renal-directed radiation therapy of 5 Gy or higher (RR, 3.8; 95% CI, 1.6–9.3).[100]
    - Those treated with platinum-based chemotherapy (RR, 3.5; 95% CI, 1.0–11.2).[100]

### Human Papillomavirus (HPV)–Associated Malignancies

Evidence (HPV-associated SMNs):

1. A CCSS study evaluated the occurrence of cancer types in which HPV is an established etiologic risk factor. The study included 24,363 childhood cancer survivors who were a median of 21 years from diagnosis.[106]
  - The 30-year cumulative incidence of an HPV-associated cancer was 0.3% (95% CI, 0.2%–0.4%), reflecting an almost threefold excess risk (SIR, 2.86; 95% CI, 2.05–4.00) to that of the general population.
  - Male and female cancer survivors had an elevated risk of HPV-associated oropharyngeal (SIR in males, 4.06; SIR in females, 8.44) and anorectal (SIR in males, 13.56; SIR in females, 9.16) SMNs. However, females were not at increased risk of cervical or vulvar cancers, compared with the general population.
  - Independent risk factors for HPV-associated cancers identified by multivariable modeling included male sex (vs. females: relative SIR, 1.99; 95% CI, 1.00–3.94); head, neck, and pelvic radiation therapy doses higher than 30 Gy (vs. none: relative SIR, 2.35; 95% CI, 1.11–4.97); and cisplatin-equivalent doses higher than 400 mg/m^2^ (vs. none: relative SIR, 4.51; 95% CI, 1.78–11.43).
2. A population-based study used Surveillance, Epidemiology, and End Results (SEER) registry data to evaluate risk factors and trends for HPV-associated SMNs among 374,408 adolescent and young adult (AYA) patients (11% were aged 15–24 years, 28% were aged 25–34 years, and 61% were aged 35–44 years at diagnosis). The patients were diagnosed between 1976 and 2015.[107]
  - The incidence of HPV-associated SMNs declined over the study period, and the overall incidence of HPV-associated SMNs among AYA cancer survivors was low, affecting only 0.4% of survivors.
  - Risk of any HPV-associated SMN was increased by 70% for AYA survivors (SIR, 1.70; 95% CI, 1.61–1.79) and 117% for oropharyngeal cancer (SIR, 2.17; 95% CI, 2.00–2.35), compared with the general population.
  - Cervical cancer risk was overall lower in survivors (SIR, 0.85; 95% CI, 0.76–0.95), but Hispanic AYA survivors had a significant increase in cervical cancer (SIR, 1.46; 95% CI, 1.01–2.06).
  - Among survivors with HPV-related first cancers, prior chemotherapy and radiation therapy were associated with any HPV-related SMN. However, those therapies were not associated with HPV-related SMNs among survivors whose first cancers were not HPV related.

### Survival Outcomes After SNs

Outcome after the diagnosis of an SN is variable, as treatment for some histological subtypes may be compromised if childhood cancer therapy included cumulative doses of agents and modalities at the threshold of tissue tolerance.

Using data from the SEER Program, individuals younger than 60 years with first primary malignancies (n = 1,332,203) were compared with childhood cancer survivors (n = 1,409) who had a second primary malignancy.[108]

- Survivors of childhood cancer diagnosed with a second primary malignancy experienced poorer overall survival than did their peers without a history of cancer (HR, 1.86; 95% Cl, 1.72–2.02) after the study had accounted for cancer type, age, sex, race, and decade of diagnosis.
- A history of childhood cancer was consistently associated with a twofold to threefold increased risk of death for the most diagnosed second primary malignancies, including breast cancer, thyroid cancer, AML, brain cancer, melanoma, bone cancer, and soft tissue sarcoma.

In a study of female participants in the CCSS who were subsequently diagnosed with breast cancer (n = 274) and matched to a control group of women (n = 1,095) with de novo breast cancer, survivors of childhood cancer were found to have elevated mortality rates (HR, 2.2; 95% CI, 1.7–3.0) even after adjusting for breast cancer treatment.[54]

- Survivors were five times more likely to die as a result of other health-related causes, including other SMNs and cardiovascular or pulmonary disease (HR, 5.5; 95% CI, 3.4–9.0).
- The cumulative incidence of a second asynchronous breast cancer was elevated significantly compared with controls (at 5 years, 8.0% among childhood cancer survivors vs. 2.7% among controls; P < .001).

### Subsequent Neoplasms and Genetic Susceptibility

Literature clearly supports the role of chemotherapy and radiation therapy in the development of SNs. However, interindividual variability exists, suggesting that genetic variation has a role in susceptibility to genotoxic exposures, or that genetic susceptibility syndromes confer an increased risk of cancer, such as Li-Fraumeni syndrome.[109,110] In a population-based Swiss Childhood Cancer Survivor Study, cancer predisposition syndromes were associated with a high risk of second primary neoplasms before the age of 21 years and represented the most important risk factor (HR, 7.8; 95% CI, 4.8–12.7) for developing a second primary cancer.[111]

Previous studies have demonstrated that childhood cancer survivors with a family history of Li-Fraumeni syndrome in particular, or a family history of cancer, carry an increased risk of developing an SN.[112,113] A prospective registry followed 480 individuals with pathogenic or likely pathogenic germline TP53 variants.[114] Individuals who developed a first cancer were monitored for the development of a second malignant neoplasm. Among individuals who were younger than 17 years at the time of diagnosis of their first cancer, 50% developed a second cancer within 20 years.

The risk of SNs could potentially be modified by variants in high-penetrance genes that lead to these serious genetic diseases (e.g., Li-Fraumeni syndrome).[113] However, the attributable risk is expected to be very small because of the extremely low prevalence of variants in high-penetrance genes.

Likewise, children with neurofibromatosis type 1 (NF1) who develop a primary tumor are at an increased risk of SNs compared with childhood cancer survivors without NF1. Treatment with radiation, but not alkylating agents, increases the risk of SNs in survivors with NF1.[115] SNs represent a major contributor to excess mortality in adult survivors of childhood glioma with NF1.[116] These survivors developed late-onset (>5 years from diagnosis) SMNs at four times the rate of glioma survivors without NF1 (4.02; range, 2.12–7.62). The 30-year, all-cause late mortality rate was 46.3% (95% CI, 23.9%–62.2%) in glioma survivors with NF1, compared with 18% (95% CI, 16.1%–20.0%) in glioma survivors without NF1. The most common causes of death among survivors with NF1 and glioma were SNs.

Table 1 summarizes the spectrum of neoplasms, affected genes, and Mendelian mode of inheritance of selected syndromes of inherited cancer predisposition.

Table 1. Selected Syndromes of Inherited Cancer Predisposition^a^

Syndrome | Major Tumor Types | Affected Gene | Mode of Inheritance
Adenomatous polyposis of the colon | Colon, hepatoblastoma, intestinal cancers, stomach, thyroid cancer | APC | Dominant
Ataxia-telangiectasia | Leukemia, lymphoma | ATM | Recessive
Beckwith-Wiedemann syndrome | Adrenal carcinoma, hepatoblastoma, rhabdomyosarcoma, Wilms tumor | CDKN1C, NSD1 | Dominant
Bloom syndrome | Leukemia, lymphoma, skin cancer | BLM | Recessive
Diamond-Blackfan anemia | Colon cancer, osteogenic sarcoma, AML/MDS | RPS19 and other RP genes | Dominant, spontaneous^b^
Fanconi anemia | Gynecological tumors, leukemia, squamous cell carcinoma | FANCA, FANCB, FANCC, FANCD2, FANCE, FANCF, FANCG | Recessive
Juvenile polyposis syndrome | Gastrointestinal tumors | SMAD4 | Dominant
Li-Fraumeni syndrome | Adrenocortical carcinoma, brain tumor, breast carcinoma, leukemia, osteosarcoma, soft tissue sarcoma | TP53 | Dominant
Multiple endocrine neoplasia 1 | Pancreatic islet cell tumor, parathyroid adenoma, pituitary adenoma | MEN1 | Dominant
Multiple endocrine neoplasia 2 | Medullary thyroid carcinoma, pheochromocytoma | RET | Dominant
Neurofibromatosis type 1 | Neurofibroma, optic pathway glioma, peripheral nerve sheath tumor | NF1 | Dominant
Neurofibromatosis type 2 | Vestibular schwannoma | NF2 | Dominant
Nevoid basal cell carcinoma syndrome | Basal cell carcinoma, medulloblastoma | PTCH | Dominant
Peutz-Jeghers syndrome | Intestinal cancers, ovarian carcinoma, pancreatic carcinoma | STK11 | Dominant
Retinoblastoma | Osteosarcoma, retinoblastoma | RB1 | Dominant
Tuberous sclerosis | Hamartoma, renal angiomyolipoma, renal cell carcinoma | TSC1, TSC2 | Dominant
von Hippel-Lindau syndrome | Hemangioblastoma, pheochromocytoma, renal cell carcinoma, retinal and central nervous system tumors | VHL | Dominant
WAGR syndrome | Gonadoblastoma, Wilms tumor | WT1 | Dominant
Wilms tumor syndrome | Wilms tumor | WT1 | Dominant
Xeroderma pigmentosum | Leukemia, melanoma | XPA, XPB, XPC, XPD, XPE, XPF, XPG, POLH | Recessive

AML = acute myeloid leukemia; MDS = myelodysplastic syndromes; WAGR = Wilms tumor, aniridia, genitourinary abnormalities, and range of developmental delays.

^a^Adapted from Strahm et al.[117]

^b^Dominant in a fraction of patients, spontaneous variants can occur.

The McGill Interactive Pediatric OncoGenetic Guidelines (MIPOGG) tool (https://mipogg.com/) identifies children with cancer who have an increased likelihood of having a cancer predisposition syndrome. This tool guides clinicians through a series of yes or no questions, and it generates a recommendation for or against genetic evaluation.[118,119]

- In a population-based, nested, case-control study, the MIPOGG tool identified survivors who were at increased risk of developing SMNs, after controlling for radiation and chemotherapy exposures (HR, 1.53; 95% CI, 1.06–2.19).
- SMN prediction was superior in survivors of CNS and solid tumor neoplasms and in survivors who were not irradiated during treatment of their primary malignancy.
- Use of the MIPOGG tool in pediatric oncology patients, at diagnosis or in survivorship follow-up, may help prioritize those who should undergo genetic evaluation.

#### Drug-metabolizing enzymes and DNA repair polymorphisms

The interindividual variability in risk of SNs is more likely related to common polymorphisms in low-penetrance genes that regulate the availability of active drug metabolites or are responsible for DNA repair. Gene-environment interactions may magnify subtle functional differences resulting from genetic variations.

In related research, SJLIFE investigators evaluated cancer treatments and pathogenic germline variants in 127 genes from six major DNA repair pathways to identify childhood cancer survivors at an increased risk of SNs.[120]

- Among 4,402 survivors who underwent whole-genome sequencing, 495 (11.2%) developed 1,269 SNs.
- Among 508 survivors (11.5%), 538 pathogenic germline variants were identified in 98 DNA repair pathways (e.g., POLG, MUTYH, ERCC2, and BRCA2).
  The following three groups were identified to have an elevated risk of SNs:
  - Female survivors with variants in homologous recombination genes who were treated with high doses (≥20 Gy) of chest radiation (RR, 4.4; 95% CI, 1.6–12.4) or a cumulative dose of anthracyclines in the second or third tertile (RR, 4.4; 95% CI, 1.7–11.4) had a significantly increased risk of breast cancer.
  - Survivors with variants in homologous recombination genes who received alkylating agent doses in the third tertile had an increased rate of subsequent sarcomas (RR, 14.9; 95% CI, 4.0–38.0).
  - Survivors with variants in nucleotide excision repair genes who were treated with neck radiation (≥30 Gy) had an increased risk of subsequent thyroid cancer (RR, 12.9; 95% CI, 1.6–46.6).

##### Drug-metabolizing enzymes

Metabolism of genotoxic agents occurs in two phases.

1. Phase I involves activation of substrates into highly reactive electrophilic intermediates that can damage DNA, a reaction principally performed by the cytochrome p450 (CYP) family of enzymes.
2. Phase II enzymes (conjugation) function to inactivate genotoxic substrates. The phase II proteins comprise the glutathione S-transferase (GST) enzymes, NAD(P)H:quinone oxidoreductase-1 (NQO1) enzyme, and others.

The balance between the two sets of enzymes is critical to the cellular response to xenobiotics; for example, high activity of a phase I enzyme and low activity of a phase II enzyme can result in DNA damage.

##### DNA repair polymorphisms

DNA repair mechanisms protect somatic cells from variants in tumor suppressor genes and oncogenes that can lead to cancer initiation and progression. An individual’s DNA repair capacity appears to be genetically determined.[121] A number of DNA repair genes contain polymorphic variants, resulting in large interindividual variations in DNA repair capacity.[121] Evaluation of the contribution of polymorphisms influencing DNA repair to the risk of SN represents an active area of research.

#### Polygenic risk

Survivors of childhood cancer are at an increased risk of subsequent cancers attributable to the late effects of radiation therapy and other treatment exposures. To better understand the impact of genetic predisposition on this risk, several studies have examined radiation-related cancers and chemotherapy only–related cancers.

Investigators combined genotype data for 11,220 5-year survivors from the CCSS and SJLIFE cohort study. They conducted a comprehensive investigation of general population, cancer-specific polygenic risk scores (PRS) derived from genome-wide association study findings. The study aimed to identify whether the PRS were associated with subsequent cancer risk among survivors of childhood cancer, after controlling for treatment exposure and nongenetic risk factors. They also quantified joint associations between radiation therapy and PRS to understand the potential interplay between genetic and treatment risk factors.[122]

- In survivors of predominantly European ancestry, standardized PRS were significantly associated with the risk of subsequent BCCs (OR, 1.37; n = 958), female breast cancers (OR, 1.42; n = 360), thyroid cancers (OR, 1.48; n = 259), squamous cell carcinomas (OR, 1.20; n = 127), and melanomas (OR, 1.60; n = 103). The association between colorectal cancer PRS and subsequent colorectal cancer risk did not reach the threshold for statistical significance (OR, 1.19; n = 67).
- Childhood cancer survivors with a higher PRS and who received radiation therapy had more-than-additive increased risks of developing BCCs, breast cancers, and thyroid cancers.
- For female survivors who were exposed to chest radiation therapy (>10 Gy), those with high PRS had an increased cumulative incidence of subsequent breast cancer by age 50 years, compared with those with low PRS.

With the decreased use of radiation therapy, it has become important to define the role of genetic susceptibility in chemotherapy-related SMNs. SJLIFE cohort study investigators evaluated treatment-related SMNs among long-term survivors of childhood cancer. An externally validated 179-variant PRS associated with risks of common adult-onset cancers in the general population was calculated for each survivor.[123]

- The most frequent SMNs developing in 1,594 survivors included BCC (n = 822), breast cancer (n = 235), and thyroid cancer (n = 221).
- SMN risk associations with the PRS were extremely modest in survivors with European ancestry who were exposed to radiation therapy (HR, 1.22; n = 4,630).
- Among survivors with European ancestry who did not receive radiation therapy (n = 4,322), the increase in 30-year SMN cumulative incidence and HRs comparing top and bottom PRS quintiles was statistically significant for those treated with alkylating agents (17% vs. 6%; HR, 2.46; P < .01), anthracyclines (20% vs. 8%; HR, 2.86; P < .001), epipodophyllotoxins (23% vs. 1%; HR, 12.20; P < .001), or platinums (46% vs. 7%; HR, 8.58; P < .01).
- Among survivors with African ancestry who did not receive radiation therapy (n = 414), the PRS also significantly predicted epipodophyllotoxin-related SMN risk. The greatest improvements in risk prediction were for survivors who were exposed to epipodophyllotoxins (HR, 2.68; P < .01).

### Screening and Follow-Up for Subsequent Neoplasms

Vigilant screening is important for childhood cancer survivors at risk.[124] Because of the relatively small size of the pediatric cancer survivor population and the prevalence and time to onset of therapy-related complications, undertaking clinical studies to assess the impact of screening recommendations on the morbidity and mortality associated with the late effect is not feasible.

Well-conducted studies of large populations of childhood cancer survivors have provided compelling evidence linking specific therapeutic exposures and late effects. This evidence has been used by several national and international cooperative groups (Scottish Collegiate Guidelines Network, Children’s Cancer and Leukaemia Group, Children's Oncology Group [COG] (https://childrensoncologygroup.org/), DCOG) to develop consensus-based clinical practice guidelines to increase awareness and standardize the immediate care needs of medically vulnerable childhood cancer survivors.[125]

All pediatric cancer survivor health screening guidelines employ a hybrid approach that is both evidence-based (using established associations between therapeutic exposures and late effects to identify high-risk categories) and grounded in the collective clinical experience of experts (matching the magnitude of the risk with the intensity of the screening recommendations). The screening recommendations in these guidelines represent a statement of consensus from a panel of experts in the late effects of pediatric cancer treatment.[124,125]

The COG Guidelines for malignant SNs indicate that certain high-risk populations of childhood cancer survivors merit heightened surveillance because of predisposing host, behavioral, or therapeutic factors.[124]

- Screening for leukemia: MDS-pCT or AML-pCT usually manifests within 10 years after exposure. Recommendations include monitoring with history and physical examination for signs and symptoms of pancytopenia for 10 years after exposure to alkylating agents or topoisomerase II inhibitors.
- Screening after radiation exposure: Most other SNs are associated with radiation exposure and usually manifest more than 10 years after exposure. Screening recommendations include careful annual physical examination of the skin and exposed (often underlying) tissues in the radiation field.
  Specific comments about screening for more common radiation-associated SNs are as follows:
  - Screening for early-onset skin cancer: Annual dermatological examination focusing on skin lesions and pigmented nevi in the radiation field is recommended. Survivors are counseled about the following:
    - Increased risk of skin cancer.
    - Potential exacerbation of risk through tanning.
    - Benefits of adhering to behaviors to protect the skin from excessive UV radiation exposure.
  - Screening for early-onset breast cancer: Because outcome after breast cancer is directly linked to stage at diagnosis, close surveillance that results in early diagnosis may improve survival.[126] Several pediatric cancer groups have endorsed the recommendation for early (before population breast cancer screening) initiation of breast cancer surveillance using mammography, breast MRI, or both imaging modalities in young women who were treated with chest irradiation.[126]
    Mammography, the most widely accepted screening tool for breast cancer in the general population, may not be the ideal screening tool by itself for radiation-related breast cancers occurring in relatively young women with dense breasts. On the basis of research among young women with inherited susceptibility to breast cancer, dual-imaging modalities may enhance early detection related to the higher sensitivity of MRI in detecting lesions in premenopausal dense breasts and the superiority of mammography in identifying ductal carcinoma in situ;[127-129] therefore, the American Cancer Society recommends including adjunct screening with MRI.[130] The high sensitivity and specificity in detecting early-stage lesions with dual-imaging surveillance is offset by a substantial rate of additional investigations attributable to false-positive results.[129]
    Many clinicians are concerned about potential harms related to radiation exposure associated with annual mammography in these young women. In this regard, it is important to consider that the estimated mean breast dose with contemporary standard two-view screening mammograms is about 3.85 mGy to 4.5 mGy.[131-133] Thus, 15 additional surveillance mammograms from age 25 to 39 years would increase the total radiation exposure in a woman treated with 20 Gy of chest radiation to 20.05775 Gy. The benefits of detection of early breast cancer lesions in high-risk women must be balanced by the risk predisposed by a 0.3% additional radiation exposure.
    To keep young women engaged in breast health surveillance, the COG Guideline recommends the following for females who received a radiation dose of 10 Gy or higher to the mantle, mediastinal, whole lung, and axillary fields:
    - Monthly breast self-examination beginning at puberty.
    - Annual clinical breast examinations beginning at puberty until age 25 years.
    - A clinical breast examination every 6 months, with annual mammograms and MRIs beginning 8 years after radiation therapy or at age 25 years (whichever occurs later).
    The risk of breast cancer in patients who received less than 10 Gy of radiation with potential impact to the breast is of a lower magnitude compared with those who received 10 Gy or higher. Monitoring of patients treated with less than 10 Gy of radiation with potential impact to the breast is determined on an individual basis after a discussion with the provider regarding the benefits and risk/harms of screening. If a decision is made to screen, the recommendations for women exposed to 10 Gy or higher are used.
  - Screening for thyroid cancer: Surveillance recommendations for thyroid cancer among survivors treated with radiation therapy to the thyroid gland vary a great deal. Consensus recommendations for surveillance were developed by the International Guidelines Harmonization Group (IGHG) with the PanCareSurFup consortium. Ultimately, neither of the two surveillance strategies, thyroid ultrasonography and neck palpation, was demonstrated to be superior. This finding highlights the need for shared decision-making between the medical provider and patient.[134]
  - Screening for subsequent CNS neoplasms: The IGHG identified a paucity of high-quality evidence for CNS screening. The group determined there was insufficient evidence to establish whether early CNS neoplasm detection results in reduced morbidity and/or mortality. Therefore, a recommendation was not made for or against MRI surveillance. Shared decision-making between the medical provider and survivor is recommended to formulate a screening plan.[68]
  - Screening for early-onset colorectal cancer: Screening of those at risk of early-onset colorectal cancer (i.e., radiation doses of 20 Gy or higher to the abdomen, pelvis, or spine) includes colonoscopy every 5 years or multitarget stool DNA test every 3 years beginning at age 30 years or 5 years after radiation therapy (whichever occurs later). For more information, see the COG Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### References

Mertens AC, Liu Q, Neglia JP, et al.: Cause-specific late mortality among 5-year survivors of childhood cancer: the Childhood Cancer Survivor Study. J Natl Cancer Inst 100 (19): 1368-79, 2008.18812549
Friedman DL, Whitton J, Leisenring W, et al.: Subsequent neoplasms in 5-year survivors of childhood cancer: the Childhood Cancer Survivor Study. J Natl Cancer Inst 102 (14): 1083-95, 2010.20634481
Turcotte LM, Whitton JA, Friedman DL, et al.: Risk of Subsequent Neoplasms During the Fifth and Sixth Decades of Life in the Childhood Cancer Survivor Study Cohort. J Clin Oncol 33 (31): 3568-75, 2015.26261260
Turcotte LM, Liu Q, Yasui Y, et al.: Temporal Trends in Treatment and Subsequent Neoplasm Risk Among 5-Year Survivors of Childhood Cancer, 1970-2015. JAMA 317 (8): 814-824, 2017.28245323
Stiller CA, Bunch KJ, Bayne AM, et al.: Subsequent cancers within 5 years from initial diagnosis of childhood cancer. Patterns and risks in the population of Great Britain. Pediatr Blood Cancer 70 (5): e30258, 2023.36815611
Withrow DR, Anderson H, Armstrong GT, et al.: Pooled Analysis of Meningioma Risk Following Treatment for Childhood Cancer. JAMA Oncol 8 (12): 1756-1764, 2022.36201196
Armstrong GT, Liu W, Leisenring W, et al.: Occurrence of multiple subsequent neoplasms in long-term survivors of childhood cancer: a report from the childhood cancer survivor study. J Clin Oncol 29 (22): 3056-64, 2011.21709189
van Eggermond AM, Schaapveld M, Lugtenburg PJ, et al.: Risk of multiple primary malignancies following treatment of Hodgkin lymphoma. Blood 124 (3): 319-27; quiz 466, 2014.24740811
Bowers DC, Moskowitz CS, Chou JF, et al.: Morbidity and Mortality Associated With Meningioma After Cranial Radiotherapy: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 35 (14): 1570-1576, 2017.28339329
Kok JL, Teepen JC, van Leeuwen FE, et al.: Risk of benign meningioma after childhood cancer in the DCOG-LATER cohort: contributions of radiation dose, exposed cranial volume, and age. Neuro Oncol 21 (3): 392-403, 2019.30099534
Verbruggen LC, Kok JL, Teepen JC, et al.: Clinical characteristics of subsequent histologically confirmed meningiomas in long-term childhood cancer survivors: A Dutch LATER study. Eur J Cancer 150: 240-249, 2021.33934061
Turcotte LM, Liu Q, Yasui Y, et al.: Chemotherapy and Risk of Subsequent Malignant Neoplasms in the Childhood Cancer Survivor Study Cohort. J Clin Oncol 37 (34): 3310-3319, 2019.31622130
Teepen JC, van Leeuwen FE, Tissing WJ, et al.: Long-Term Risk of Subsequent Malignant Neoplasms After Treatment of Childhood Cancer in the DCOG LATER Study Cohort: Role of Chemotherapy. J Clin Oncol 35 (20): 2288-2298, 2017.28530852
Wang Z, Wilson CL, Easton J, et al.: Genetic Risk for Subsequent Neoplasms Among Long-Term Survivors of Childhood Cancer. J Clin Oncol 36 (20): 2078-2087, 2018.29847298
Allodji RS, Hawkins MM, Bright CJ, et al.: Risk of subsequent primary leukaemias among 69,460 five-year survivors of childhood cancer diagnosed from 1940 to 2008 in Europe: A cohort study within PanCareSurFup. Eur J Cancer 117: 71-83, 2019.31260818
Allodji RS, Tucker MA, Hawkins MM, et al.: Role of radiotherapy and chemotherapy in the risk of leukemia after childhood cancer: An international pooled analysis. Int J Cancer 148 (9): 2079-2089, 2021.33105035
Ghosh T, Hyun G, Dhaduk R, et al.: Late subsequent leukemia after childhood cancer: A report from the Childhood Cancer Survivor Study (CCSS). Cancer Med 13 (20): e70086, 2024.39431920
Bhatia S, Yasui Y, Robison LL, et al.: High risk of subsequent neoplasms continues with extended follow-up of childhood Hodgkin's disease: report from the Late Effects Study Group. J Clin Oncol 21 (23): 4386-94, 2003.14645429
Nottage K, Lanctot J, Li Z, et al.: Long-term risk for subsequent leukemia after treatment for childhood cancer: a report from the Childhood Cancer Survivor Study. Blood 117 (23): 6315-8, 2011.21498675
Khoury JD, Solary E, Abla O, et al.: The 5th edition of the World Health Organization Classification of Haematolymphoid Tumours: Myeloid and Histiocytic/Dendritic Neoplasms. Leukemia 36 (7): 1703-1719, 2022.35732831
Thirman MJ, Larson RA: Therapy-related myeloid leukemia. Hematol Oncol Clin North Am 10 (2): 293-320, 1996.8707757
Pedersen-Bjergaard J, Philip P: Balanced translocations involving chromosome bands 11q23 and 21q22 are highly characteristic of myelodysplasia and leukemia following therapy with cytostatic agents targeting at DNA-topoisomerase II. Blood 78 (4): 1147-8, 1991.1651134
Kok JL, Teepen JC, van der Pal HJ, et al.: Incidence of and Risk Factors for Histologically Confirmed Solid Benign Tumors Among Long-term Survivors of Childhood Cancer. JAMA Oncol 5 (5): 671-680, 2019.30920605
Inskip PD, Sigurdson AJ, Veiga L, et al.: Radiation-Related New Primary Solid Cancers in the Childhood Cancer Survivor Study: Comparative Radiation Dose Response and Modification of Treatment Effects. Int J Radiat Oncol Biol Phys 94 (4): 800-7, 2016.26972653
Ehrhardt MJ, Howell CR, Hale K, et al.: Subsequent Breast Cancer in Female Childhood Cancer Survivors in the St Jude Lifetime Cohort Study (SJLIFE). J Clin Oncol 37 (19): 1647-1656, 2019.31075046
Taylor AJ, Little MP, Winter DL, et al.: Population-based risks of CNS tumors in survivors of childhood cancer: the British Childhood Cancer Survivor Study. J Clin Oncol 28 (36): 5287-93, 2010.21079138
Henderson TO, Whitton J, Stovall M, et al.: Secondary sarcomas in childhood cancer survivors: a report from the Childhood Cancer Survivor Study. J Natl Cancer Inst 99 (4): 300-8, 2007.17312307
Veiga LH, Holmberg E, Anderson H, et al.: Thyroid Cancer after Childhood Exposure to External Radiation: An Updated Pooled Analysis of 12 Studies. Radiat Res 185 (5): 473-84, 2016.27128740
Reulen RC, Frobisher C, Winter DL, et al.: Long-term risks of subsequent primary neoplasms among survivors of childhood cancer. JAMA 305 (22): 2311-9, 2011.21642683
Teepen JC, Kok JL, Kremer LC, et al.: Long-Term Risk of Skin Cancer Among Childhood Cancer Survivors: A DCOG-LATER Cohort Study. J Natl Cancer Inst 111 (8): 845-853, 2019.30802904
Majhail NS, Brazauskas R, Rizzo JD, et al.: Secondary solid cancers after allogeneic hematopoietic cell transplantation using busulfan-cyclophosphamide conditioning. Blood 117 (1): 316-22, 2011.20926773
Baker KS, Leisenring WM, Goodman PJ, et al.: Total body irradiation dose and risk of subsequent neoplasms following allogeneic hematopoietic cell transplantation. Blood 133 (26): 2790-2799, 2019.30992266
Veiga LH, Curtis RE, Morton LM, et al.: Association of Breast Cancer Risk After Childhood Cancer With Radiation Dose to the Breast and Anthracycline Use: A Report From the Childhood Cancer Survivor Study. JAMA Pediatr 173 (12): 1171-1179, 2019.31657853
Kenney LB, Yasui Y, Inskip PD, et al.: Breast cancer after childhood cancer: a report from the Childhood Cancer Survivor Study. Ann Intern Med 141 (8): 590-7, 2004.15492338
Moskowitz CS, Chou JF, Wolden SL, et al.: Breast cancer after chest radiation therapy for childhood cancer. J Clin Oncol 32 (21): 2217-23, 2014.24752044
Henderson TO, Liu Q, Turcotte LM, et al.: Association of Changes in Cancer Therapy Over 3 Decades With Risk of Subsequent Breast Cancer Among Female Childhood Cancer Survivors: A Report From the Childhood Cancer Survivor Study (CCSS). JAMA Oncol : , 2022.36227603
Schaapveld M, Aleman BM, van Eggermond AM, et al.: Second Cancer Risk Up to 40 Years after Treatment for Hodgkin's Lymphoma. N Engl J Med 373 (26): 2499-511, 2015.26699166
Travis LB, Hill D, Dores GM, et al.: Cumulative absolute breast cancer risk for young women treated for Hodgkin lymphoma. J Natl Cancer Inst 97 (19): 1428-37, 2005.16204692
O'Brien MM, Donaldson SS, Balise RR, et al.: Second malignant neoplasms in survivors of pediatric Hodgkin's lymphoma treated with low-dose radiation and chemotherapy. J Clin Oncol 28 (7): 1232-9, 2010.20124178
Inskip PD, Robison LL, Stovall M, et al.: Radiation dose and breast cancer risk in the childhood cancer survivor study. J Clin Oncol 27 (24): 3901-7, 2009.19620485
Travis LB, Hill DA, Dores GM, et al.: Breast cancer following radiotherapy and chemotherapy among young women with Hodgkin disease. JAMA 290 (4): 465-75, 2003.12876089
van Leeuwen FE, Klokman WJ, Stovall M, et al.: Roles of radiation dose, chemotherapy, and hormonal factors in breast cancer following Hodgkin's disease. J Natl Cancer Inst 95 (13): 971-80, 2003.12837833
Lange JM, Takashima JR, Peterson SM, et al.: Breast cancer in female survivors of Wilms tumor: a report from the national Wilms tumor late effects study. Cancer 120 (23): 3722-30, 2014.25348097
Wang Y, Ronckers CM, van Leeuwen FE, et al.: Subsequent female breast cancer risk associated with anthracycline chemotherapy for childhood cancer. Nat Med 29 (9): 2268-2277, 2023.37696934
Henderson TO, Moskowitz CS, Chou JF, et al.: Breast Cancer Risk in Childhood Cancer Survivors Without a History of Chest Radiotherapy: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 34 (9): 910-8, 2016.26700127
Eisenberg ER, Weiss A, Prakash I, et al.: Surgical Management and Contralateral Breast Cancer Risk in Women with History of Radiation Therapy for Hodgkin Lymphoma: Results from a Population-Based Cohort. Ann Surg Oncol 29 (11): 6673-6680, 2022.35668306
Moskowitz CS, Ronckers CM, Chou JF, et al.: Development and Validation of a Breast Cancer Risk Prediction Model for Childhood Cancer Survivors Treated With Chest Radiation: A Report From the Childhood Cancer Survivor Study and the Dutch Hodgkin Late Effects and LATER Cohorts. J Clin Oncol 39 (27): 3012-3021, 2021.34048292
Dores GM, Anderson WF, Beane Freeman LE, et al.: Risk of breast cancer according to clinicopathologic features among long-term survivors of Hodgkin's lymphoma treated with radiotherapy. Br J Cancer 103 (7): 1081-4, 2010.20842115
Horst KC, Hancock SL, Ognibene G, et al.: Histologic subtypes of breast cancer following radiotherapy for Hodgkin lymphoma. Ann Oncol 25 (4): 848-51, 2014.24608191
Demoor-Goldschmidt C, Supiot S, Mahé MA, et al.: Clinical and histological features of second breast cancers following radiotherapy for childhood and young adult malignancy. Br J Radiol 91 (1086): 20170824, 2018.29493262
Castiglioni F, Terenziani M, Carcangiu ML, et al.: Radiation effects on development of HER2-positive breast carcinomas. Clin Cancer Res 13 (1): 46-51, 2007.17200337
Gaffney DK, Hemmersmeier J, Holden J, et al.: Breast cancer after mantle irradiation for Hodgkin's disease: correlation of clinical, pathologic, and molecular features including loss of heterozygosity at BRCA1 and BRCA2. Int J Radiat Oncol Biol Phys 49 (2): 539-46, 2001.11173152
Wong SM, Ajjamada L, Weiss AC, et al.: Clinicopathologic features of breast cancers diagnosed in women treated with prior radiation therapy for Hodgkin lymphoma: Results from a population-based cohort. Cancer 128 (7): 1365-1372, 2022.34919263
Moskowitz CS, Chou JF, Neglia JP, et al.: Mortality After Breast Cancer Among Survivors of Childhood Cancer: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 37 (24): 2120-2130, 2019.31260644
Yeh JM, Lowry KP, Schechter CB, et al.: Clinical Benefits, Harms, and Cost-Effectiveness of Breast Cancer Screening for Survivors of Childhood Cancer Treated With Chest Radiation : A Comparative Modeling Study. Ann Intern Med 173 (5): 331-341, 2020.32628531
Vivanco M, Dalle JH, Alberti C, et al.: Malignant and benign thyroid nodules after total body irradiation preceding hematopoietic cell transplantation during childhood. Eur J Endocrinol 167 (2): 225-33, 2012.22619350
Friedman DN, Goodman PJ, Leisenring WM, et al.: Impact of risk-based therapy on late morbidity and mortality in neuroblastoma survivors: a report from the Childhood Cancer Survivor Study. J Natl Cancer Inst 116 (6): 885-894, 2024.38460547
Michaelson EM, Chen YH, Silver B, et al.: Thyroid malignancies in survivors of Hodgkin lymphoma. Int J Radiat Oncol Biol Phys 88 (3): 636-41, 2014.24521679
Sigurdson AJ, Ronckers CM, Mertens AC, et al.: Primary thyroid cancer after a first tumour in childhood (the Childhood Cancer Survivor Study): a nested case-control study. Lancet 365 (9476): 2014-23, 2005 Jun 11-17.15950715
Clement SC, Lebbink CA, Klein Hesselink MS, et al.: Presentation and outcome of subsequent thyroid cancer among childhood cancer survivors compared to sporadic thyroid cancer: a matched national study. Eur J Endocrinol 183 (2): 169-180, 2020.32449692
Casey DL, Vogelius IR, Brodin NP, et al.: Risk of Subsequent Neoplasms in Childhood Cancer Survivors After Radiation Therapy: A PENTEC Comprehensive Review. Int J Radiat Oncol Biol Phys 119 (2): 640-654, 2024.37777927
Hijiya N, Hudson MM, Lensing S, et al.: Cumulative incidence of secondary neoplasms as a first event after childhood acute lymphoblastic leukemia. JAMA 297 (11): 1207-15, 2007.17374815
Neglia JP, Robison LL, Stovall M, et al.: New primary neoplasms of the central nervous system in survivors of childhood cancer: a report from the Childhood Cancer Survivor Study. J Natl Cancer Inst 98 (21): 1528-37, 2006.17077355
Faraci M, Morana G, Bagnasco F, et al.: Magnetic resonance imaging in childhood leukemia survivors treated with cranial radiotherapy: a cross sectional, single center study. Pediatr Blood Cancer 57 (2): 240-6, 2011.21671360
Vinchon M, Leblond P, Caron S, et al.: Radiation-induced tumors in children irradiated for brain tumor: a longitudinal study. Childs Nerv Syst 27 (3): 445-53, 2011.21234575
Koike T, Yanagimachi N, Ishiguro H, et al.: High incidence of radiation-induced cavernous hemangioma in long-term survivors who underwent hematopoietic stem cell transplantation with radiation therapy during childhood or adolescence. Biol Blood Marrow Transplant 18 (7): 1090-8, 2012.22198541
Heymer EJ, Hawkins MM, Winter DL, et al.: Risk of subsequent gliomas and meningiomas among 69,460 5-year survivors of childhood and adolescent cancer in Europe: the PanCareSurFup study. Br J Cancer 130 (6): 976-986, 2024.38243010
Bowers DC, Verbruggen LC, Kremer LCM, et al.: Surveillance for subsequent neoplasms of the CNS for childhood, adolescent, and young adult cancer survivors: a systematic review and recommendations from the International Late Effects of Childhood Cancer Guideline Harmonization Group. Lancet Oncol 22 (5): e196-e206, 2021.33845037
Baliga S, Gallotto S, Bajaj B, et al.: Decade-long disease, secondary malignancy, and brainstem injury outcomes in pediatric and young adult medulloblastoma patients treated with proton radiotherapy. Neuro Oncol 24 (6): 1010-1019, 2022.34788463
Wong JR, Morton LM, Tucker MA, et al.: Risk of subsequent malignant neoplasms in long-term hereditary retinoblastoma survivors after chemotherapy and radiotherapy. J Clin Oncol 32 (29): 3284-90, 2014.25185089
Fidler MM, Reulen RC, Winter DL, et al.: Risk of Subsequent Bone Cancers Among 69 460 Five-Year Survivors of Childhood and Adolescent Cancer in Europe. J Natl Cancer Inst 110 (2): , 2018.28954302
Bright CJ, Hawkins MM, Winter DL, et al.: Risk of Soft-Tissue Sarcoma Among 69 460 Five-Year Survivors of Childhood Cancer in Europe. J Natl Cancer Inst 110 (6): 649-660, 2018.29165710
Chaussade A, Millot G, Wells C, et al.: Correlation between RB1germline mutations and second primary malignancies in hereditary retinoblastoma patients treated with external beam radiotherapy. Eur J Med Genet 62 (3): 217-223, 2019.30031154
Kube SJ, Blattmann C, Bielack SS, et al.: Secondary malignant neoplasms after bone and soft tissue sarcomas in children, adolescents, and young adults. Cancer 128 (9): 1787-1800, 2022.35195899
Schwartz B, Benadjaoud MA, Cléro E, et al.: Risk of second bone sarcoma following childhood cancer: role of radiation therapy treatment. Radiat Environ Biophys 53 (2): 381-90, 2014.24419490
Bielack SS, Blattmann C, Hassenpflug W, et al.: Osteosarcoma Arising After Ewing Sarcoma or Vice Versa: A Report of 20 Affected Patients from the Cooperative Osteosarcoma Study Group (COSS). Anticancer Res 43 (11): 4975-4981, 2023.37909999
Henderson TO, Rajaraman P, Stovall M, et al.: Risk factors associated with secondary sarcomas in childhood cancer survivors: a report from the childhood cancer survivor study. Int J Radiat Oncol Biol Phys 84 (1): 224-30, 2012.22795729
Reulen RC, Winter DL, Diallo I, et al.: Risk Factors for Primary Bone Cancer After Childhood Cancer: A PanCare Childhood and Adolescent Cancer Survivor Care and Follow-Up Studies Nested Case-Control Study. J Clin Oncol 41 (21): 3735-3746, 2023.37235821
MacCarthy A, Bayne AM, Brownbill PA, et al.: Second and subsequent tumours among 1927 retinoblastoma patients diagnosed in Britain 1951-2004. Br J Cancer 108 (12): 2455-63, 2013.23674091
Temming P, Arendt M, Viehmann A, et al.: Incidence of second cancers after radiotherapy and systemic chemotherapy in heritable retinoblastoma survivors: A report from the German reference center. Pediatr Blood Cancer 64 (1): 71-80, 2017.27567086
Kleinerman RA, Schonfeld SJ, Sigel BS, et al.: Bone and Soft-Tissue Sarcoma Risk in Long-Term Survivors of Hereditary Retinoblastoma Treated With Radiation. J Clin Oncol 37 (35): 3436-3445, 2019.31622129
Thorsness SL, Freites-Martinez A, Marchetti MA, et al.: Nonmelanoma Skin Cancer in Childhood and Young Adult Cancer Survivors Previously Treated With Radiotherapy. J Natl Compr Canc Netw 17 (3): 237-243, 2019.30865918
Boull C, Chen Y, Im C, et al.: Keratinocyte carcinomas in survivors of childhood cancer: A report from the childhood cancer survivor study. J Am Acad Dermatol 91 (6): 1125-1135, 2024.39182687
Geller AC, Coroiu A, Keske RR, et al.: Advancing Survivors Knowledge (ASK Study) of Skin Cancer Surveillance After Childhood Cancer: A Randomized Controlled Trial in the Childhood Cancer Survivor Study. J Clin Oncol 41 (12): 2269-2280, 2023.36623247
Rotz SJ, Stratton K, Leisenring WM, et al.: Melanoma Among Adult Survivors of Childhood Cancer: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 43 (10): 1219-1228, 2025.39778123
Braam KI, Overbeek A, Kaspers GJ, et al.: Malignant melanoma as second malignant neoplasm in long-term childhood cancer survivors: a systematic review. Pediatr Blood Cancer 58 (5): 665-74, 2012.22232079
Kleinerman RA, Schonfeld SJ, Abramson DH, et al.: Increased Risk of Skin Cancer in 1,851 Long-Term Retinoblastoma Survivors. J Invest Dermatol 141 (12): 2849-2857.e3, 2021.34153328
Ghosh T, Chen Y, Dietz AC, et al.: Lung Cancer as a Subsequent Malignant Neoplasm in Survivors of Childhood Cancer. Cancer Epidemiol Biomarkers Prev 30 (12): 2235-2243, 2021.34526300
van Leeuwen FE, Klokman WJ, Stovall M, et al.: Roles of radiotherapy and smoking in lung cancer following Hodgkin's disease. J Natl Cancer Inst 87 (20): 1530-7, 1995.7563187 96003708
Henderson TO, Oeffinger KC, Whitton J, et al.: Secondary gastrointestinal cancer in childhood cancer survivors: a cohort study. Ann Intern Med 156 (11): 757-66, W-260, 2012.22665813
Nottage K, McFarlane J, Krasin MJ, et al.: Secondary colorectal carcinoma after childhood cancer. J Clin Oncol 30 (20): 2552-8, 2012.22665546
Heymer EJ, Jóźwiak K, Kremer LC, et al.: Cumulative Absolute Risk of Subsequent Colorectal Cancer After Abdominopelvic Radiotherapy Among Childhood Cancer Survivors: A PanCareSurFup Study. J Clin Oncol 42 (3): 336-347, 2024.37972325
Tukenova M, Diallo I, Anderson H, et al.: Second malignant neoplasms in digestive organs after childhood cancer: a cohort-nested case-control study. Int J Radiat Oncol Biol Phys 82 (3): e383-90, 2012.22284034
Daly PE, Samiee S, Cino M, et al.: High prevalence of adenomatous colorectal polyps in young cancer survivors treated with abdominal radiation therapy: results of a prospective trial. Gut 66 (10): 1797-1801, 2017.27411369
Teepen JC, Kok JL, van Leeuwen FE, et al.: Colorectal Adenomas and Cancers After Childhood Cancer Treatment: A DCOG-LATER Record Linkage Study. J Natl Cancer Inst 110 (7): 758-767, 2018.29986097
Reulen RC, Wong KF, Bright CJ, et al.: Risk of digestive cancers in a cohort of 69 460 five-year survivors of childhood cancer in Europe: the PanCareSurFup study. Gut : , 2020.33139271
Geurts YM, Shakir R, Ntentas G, et al.: Association of Radiation and Procarbazine Dose With Risk of Colorectal Cancer Among Survivors of Hodgkin Lymphoma. JAMA Oncol 9 (4): 481-489, 2023.36729438
Sunguc C, Hawkins MM, Winter DL, et al.: Risk of subsequent primary oral cancer in a cohort of 69,460 5-year survivors of childhood and adolescent cancer in Europe: the PanCareSurFup study. Br J Cancer 128 (1): 80-90, 2023.36319851
Liu JJ, De Vivo I, Wu CY, et al.: Subsequent primary urogenital cancers among childhood and adolescent cancer survivors in the United States. Urol Oncol 40 (2): 65.e11-65.e18, 2022.34810078
Wilson CL, Ness KK, Neglia JP, et al.: Renal carcinoma after childhood cancer: a report from the childhood cancer survivor study. J Natl Cancer Inst 105 (7): 504-8, 2013.23515901
de Vathaire F, Scwhartz B, El-Fayech C, et al.: Risk of a Second Kidney Carcinoma Following Childhood Cancer: Role of Chemotherapy and Radiation Dose to Kidneys. J Urol 194 (5): 1390-5, 2015.26143112
Hedgepeth RC, Zhou M, Ross J: Rapid development of metastatic Xp11 translocation renal cell carcinoma in a girl treated for neuroblastoma. J Pediatr Hematol Oncol 31 (8): 602-4, 2009.19636262
Argani P, Laé M, Ballard ET, et al.: Translocation carcinomas of the kidney after chemotherapy in childhood. J Clin Oncol 24 (10): 1529-34, 2006.16575003
Ma J, Pan C, Yin M: Translocation Renal Cell Carcinoma in a Child Previously Treated for Infantile Fibrosarcoma. Pediatr Dev Pathol 21 (4): 418-422, 2018 Jul-Aug.28478739
Fleitz JM, Wootton-Gorges SL, Wyatt-Ashmead J, et al.: Renal cell carcinoma in long-term survivors of advanced stage neuroblastoma in early childhood. Pediatr Radiol 33 (8): 540-5, 2003.12748834
Henderson TO, Fowler BW, Hamann HA, et al.: Subsequent malignant neoplasms in the Childhood Cancer Survivor Study: Occurrence of cancer types in which human papillomavirus is an established etiologic risk factor. Cancer 128 (2): 373-382, 2022.34606625
Ou JY, Bennion N, Parker K, et al.: Risk Factors and Trends for HPV-Associated Subsequent Malignant Neoplasms among Adolescent and Young Adult Cancer Survivors. Cancer Epidemiol Biomarkers Prev 32 (5): 625-633, 2023.37071501
Brown AL, Arroyo VM, Agrusa JE, et al.: Survival disparities for second primary malignancies diagnosed among childhood cancer survivors: A population-based assessment. Cancer 125 (20): 3623-3630, 2019.31251393
Archer NM, Amorim RP, Naves R, et al.: An Increased Risk of Second Malignant Neoplasms After Rhabdomyosarcoma: Population-Based Evidence for a Cancer Predisposition Syndrome? Pediatr Blood Cancer 63 (2): 196-201, 2016.26193998
Wang X, Sun CL, Hageman L, et al.: Clinical and Genetic Risk Prediction of Subsequent CNS Tumors in Survivors of Childhood Cancer: A Report From the COG ALTE03N1 Study. J Clin Oncol 35 (32): 3688-3696, 2017.28976792
Waespe N, Belle FN, Redmond S, et al.: Cancer predisposition syndromes as a risk factor for early second primary neoplasms after childhood cancer - A national cohort study. Eur J Cancer 145: 71-80, 2021.33423008
Andersson A, Enblad G, Tavelin B, et al.: Family history of cancer as a risk factor for second malignancies after Hodgkin's lymphoma. Br J Cancer 98 (5): 1001-5, 2008.18268493
Hisada M, Garber JE, Fung CY, et al.: Multiple primary cancers in families with Li-Fraumeni syndrome. J Natl Cancer Inst 90 (8): 606-11, 1998.9554443 98213106
de Andrade KC, Khincha PP, Hatton JN, et al.: Cancer incidence, patterns, and genotype-phenotype associations in individuals with pathogenic or likely pathogenic germline TP53 variants: an observational cohort study. Lancet Oncol 22 (12): 1787-1798, 2021.34780712
Bhatia S, Chen Y, Wong FL, et al.: Subsequent Neoplasms After a Primary Tumor in Individuals With Neurofibromatosis Type 1. J Clin Oncol 37 (32): 3050-3058, 2019.31532722
de Blank P, Li N, Fisher MJ, et al.: Late morbidity and mortality in adult survivors of childhood glioma with neurofibromatosis type 1: report from the Childhood Cancer Survivor Study. Genet Med 22 (11): 1794-1802, 2020.32572180
Strahm B, Malkin D: Hereditary cancer predisposition in children: genetic basis and clinical implications. Int J Cancer 119 (9): 2001-6, 2006.16642469
Cullinan N, Schiller I, Di Giuseppe G, et al.: Utility of a Cancer Predisposition Screening Tool for Predicting Subsequent Malignant Neoplasms in Childhood Cancer Survivors. J Clin Oncol 39 (29): 3207-3216, 2021.34383599
Goudie C, Witkowski L, Cullinan N, et al.: Performance of the McGill Interactive Pediatric OncoGenetic Guidelines for Identifying Cancer Predisposition Syndromes. JAMA Oncol 7 (12): 1806-1814, 2021.34617981
Qin N, Wang Z, Liu Q, et al.: Pathogenic Germline Mutations in DNA Repair Genes in Combination With Cancer Treatment Exposures and Risk of Subsequent Neoplasms Among Long-Term Survivors of Childhood Cancer. J Clin Oncol 38 (24): 2728-2740, 2020.32496904
Collins A, Harrington V: Repair of oxidative DNA damage: assessing its contribution to cancer prevention. Mutagenesis 17 (6): 489-93, 2002.12435846
Gibson TM, Karyadi DM, Hartley SW, et al.: Polygenic risk scores, radiation treatment exposures and subsequent cancer risk in childhood cancer survivors. Nat Med 30 (3): 690-698, 2024.38454124
Im C, Sharafeldin N, Yuan Y, et al.: Polygenic Risk and Chemotherapy-Related Subsequent Malignancies in Childhood Cancer Survivors: A Childhood Cancer Survivor Study and St Jude Lifetime Cohort Study Report. J Clin Oncol 41 (27): 4381-4393, 2023.37459583
Landier W, Bhatia S, Eshelman DA, et al.: Development of risk-based guidelines for pediatric cancer survivors: the Children's Oncology Group Long-Term Follow-Up Guidelines from the Children's Oncology Group Late Effects Committee and Nursing Discipline. J Clin Oncol 22 (24): 4979-90, 2004.15576413
Kremer LC, Mulder RL, Oeffinger KC, et al.: A worldwide collaboration to harmonize guidelines for the long-term follow-up of childhood and young adult cancer survivors: a report from the International Late Effects of Childhood Cancer Guideline Harmonization Group. Pediatr Blood Cancer 60 (4): 543-9, 2013.23281199
Mulder RL, Hudson MM, Bhatia S, et al.: Updated Breast Cancer Surveillance Recommendations for Female Survivors of Childhood, Adolescent, and Young Adult Cancer From the International Guideline Harmonization Group. J Clin Oncol 38 (35): 4194-4207, 2020.33078972
Kriege M, Brekelmans CT, Boetes C, et al.: Efficacy of MRI and mammography for breast-cancer screening in women with a familial or genetic predisposition. N Engl J Med 351 (5): 427-37, 2004.15282350
Leach MO, Boggis CR, Dixon AK, et al.: Screening with magnetic resonance imaging and mammography of a UK population at high familial risk of breast cancer: a prospective multicentre cohort study (MARIBS). Lancet 365 (9473): 1769-78, 2005 May 21-27.15910949
Tieu MT, Cigsar C, Ahmed S, et al.: Breast cancer detection among young survivors of pediatric Hodgkin lymphoma with screening magnetic resonance imaging. Cancer 120 (16): 2507-13, 2014.24888639
Saslow D, Boetes C, Burke W, et al.: American Cancer Society guidelines for breast screening with MRI as an adjunct to mammography. CA Cancer J Clin 57 (2): 75-89, 2007 Mar-Apr.17392385
Berrington de Gonzalez A, Berg CD, Visvanathan K, et al.: Estimated risk of radiation-induced breast cancer from mammographic screening for young BRCA mutation carriers. J Natl Cancer Inst 101 (3): 205-9, 2009.19176458
Young KC, Burch A, Oduko JM: Radiation doses received in the UK Breast Screening Programme in 2001 and 2002. Br J Radiol 78 (927): 207-18, 2005.15730985
Spelic DC: Trends in Mammography Dose and Image Quality 1974-2005. Silver Spring, Md: U.S. Food and Drug Administration, 2006. Available online (http://wayback.archive-it.org/7993/20170112093758/http://www.fda.gov/Radiation-EmittingProducts/MammographyQualityStandardsActandProgram/FacilityScorecard/ucm113352.htm). Last accessed August 21, 2023.
Clement SC, Kremer LCM, Verburg FA, et al.: Balancing the benefits and harms of thyroid cancer surveillance in survivors of Childhood, adolescent and young adult cancer: Recommendations from the international Late Effects of Childhood Cancer Guideline Harmonization Group in collaboration with the PanCareSurFup Consortium. Cancer Treat Rev 63: 28-39, 2018.29202445

## Late Effects of the Cardiovascular System

Cardiovascular disease, after recurrence of the original cancer and development of second primary cancers, has been reported to be the leading cause of premature mortality among long-term childhood cancer survivors.[1-3]

Evidence (excess risk of premature cardiovascular mortality):

1. In the North American Childhood Cancer Survivor Study (CCSS), more than 34,000 5-year survivors of childhood cancer were diagnosed and treated from 1970 to 1999.[1]
  - Participants followed for 15 years had a standardized mortality ratio (SMR) of 11.7 (95% confidence interval [CI], 9.4–14.4) for cardiac mortality.
  - Late cardiac mortality in children who were treated more recently (i.e., in the 1990s) appears to have decreased (e.g., the cumulative incidence was 0.5% in 1970–1974 vs. 0.1% in 1990–1994).
2. In the CCSS, outcomes for patients diagnosed and treated in adolescence and early adulthood (aged >15 to <21 years) were compared with survivors of similar cancers diagnosed in childhood (aged <15 years) and the general population.[4]
  - Childhood cancer survivors (n = 5,804) had a greater SMR than early-adolescent and young adult survivors (n = 5,804) for cardiac deaths beginning 20 years after diagnosis (SMR, 5.4; 95% CI, 3.7–7.8 vs. SMR, 1.8; 95% CI, 0.7–4.3).
  - When compared with siblings of the same age, survivors of childhood cancer (n = 4,082) had a higher risk of developing grades 3 to 5 chronic cardiac conditions than early adolescents and young adults (n = 4,082) (hazard ratio [HR], 5.6 [4.5–7.1] vs. 4.3 [3.5–5.4]).
3. The incidence and accumulation of nonmajor adverse cardiovascular events, including subclinical conditions found by screening, increases the risk of subsequent major adverse cardiovascular events in survivors of childhood cancer. A prospective longitudinal cohort study that used systematic in-person clinical assessments (St. Jude Lifetime [SJLIFE] cohort consisting of 9,602 5-year survivors and 737 community controls) reported the following:[5]
  - Increasing cumulative burden of grades 1 to 4 nonmajor adverse cardiovascular events was associated with an increased future risk of major adverse cardiovascular events (one condition: relative risk [RR], 4.3; P < .0001; two conditions: RR, 6.6; P < .0001; and three conditions: RR, 7.7; P < .0001).
  - Increased risk of major adverse cardiovascular events was observed with specific subclinical conditions such as grade 1 arrythmias (RR, 1.5; P = .0017), grade 2 left ventricular systolic dysfunction (RR, 2.2; P < .0001), and grade 2 valvular disorders (RR, 2.2; P = .013).
  - Grade 1 hypercholesterolemia, grades 1 to 2 hypertriglyceridemia, or grades 1 to 2 vascular stenosis did not increase the risk of major adverse cardiovascular events.
4. Cardiac disease becomes increasingly important as survivors of childhood cancer reach mature adulthood. This finding was observed in the population-based British Childhood Cancer Survivor Study, comprised of 34,489 5-year survivors of childhood cancer diagnosed from 1940 to 2006.[2,6]
  - In survivors of childhood cancer aged 60 years and older, circulatory disease overtakes subsequent primary neoplasms as the leading cause of excess mortality (37% of the excess number of deaths observed were caused by circulatory conditions compared with 31% of excess number of deaths caused by subsequent primary neoplasms).[2]
  - The risk of both overall cardiac and cardiomyopathy/heart failure mortality was greatest among those diagnosed between 1980 and 1989. Survivors who were diagnosed from 1980 to 1989 had 28.9 times the excess number of cardiac deaths as did survivors who were diagnosed either before 1970 or from 1990 to the present.[6]

The specific late effects covered in this section include the following:

- Cardiomyopathy/heart failure.
- Ischemic heart disease.
- Pericardial heart disease.
- Valve disease.
- Conduction disorders.
- Cerebrovascular disease.
- Venous thromboembolism.

This section will also briefly discuss the influence of related conditions such as hypertension, dyslipidemia, and diabetes. However, this section will not provide a detailed review of those conditions as a consequence of childhood cancer treatment. A comprehensive review of long-term cardiovascular toxicity in childhood and young adult survivors of cancer has been published.[7]

### Cardiovascular Outcomes

- Numerous studies focus on cardiac events among childhood cancer survivors. Very large cohort studies exist, many with several decades of follow-up, that are either hospital based,[8-10] clinical trial based,[11,12] or population based.[2,3,6]
- Notably, the average age of these populations is still relatively young (early or mid-adulthood). Consequently, the reported risk of serious cardiovascular outcomes is very high relative to the age-matched general population, whereas the absolute risk often remains low, limiting the power of many studies.
- Among the large studies featuring thousands of survivors, the main limitation has been inadequate ability to clinically ascertain late cardiovascular complications, with a greater reliance on either administrative records (e.g., death registries) and/or self-report or proxy-report.
- While each study design has some inherent biases, the overall literature, based on a combination of self-reported outcomes, clinical ascertainment, and administrative data sources, is robust. These studies conclude that certain cancer-related exposures are associated with a significantly greater risk of cardiovascular morbidity and mortality in survivors.
- Although late effects research often lags behind changes in contemporary therapy, many therapies linked to cardiovascular late effects remain in common use today. However, restricted doses of these therapies are often given to patients with biologically favorable disease presentations. In addition, dexrazoxane cardioprotection is also widely used for patients exposed to these therapies.[13-15]
- Ongoing research is important to ensure that use of newer targeted agents does not result in unexpected cardiovascular effects.[16]

Evidence (selected cohort studies describing cardiovascular outcomes):

1. A case-control study of the PanCareSurFup and ProCardio cohort evaluated treatment-related risk factors for heart failure in survivors of childhood cancer (5 or more years) diagnosed between 1940 and 2009.[17]
  - The 50-year cumulative incidence of heart failure among the entire cohort was 2% (95% CI, 1.7%–2.2%).
  - A subcohort study evaluated 500 cases with symptomatic heart failure and 500 controls without heart failure (matched for sex, age, calendar year of first diagnosis, and length of follow-up) for whom detailed treatment exposures were available. The risk of heart failure was increased more than fivefold (odds ratio [OR], 5.5; 95% CI, 2.5–12.3) among survivors who received a mean heart radiation therapy dose of 5 Gy to 15 Gy or less, compared with those who did not receive heart radiation therapy. The risk increased with a larger volume of radiation exposing the heart.
  - Heart failure risk increased in a linear fashion with higher mean heart radiation therapy doses.
  - Survivors who received a cumulative anthracycline dose of more than 100 mg/m^2^ had a substantially increased risk of heart failure (OR, 5.8; 95% CI, 2.9–11.3 for 100 to <250 mg/m^2^ and OR, 21.2; 95% CI, 11.4–39.2 for >250 mg/m^2^).
  - An anthracycline dose of less than 100 mg/m^2^ was not a significant risk factor for heart failure.
2. CCSS investigators reported on major cardiac events among participants diagnosed with childhood cancer between 1970 and 1999.[18]
  - In this update, the 20-year cumulative incidence of heart failure and coronary artery disease for patients treated in the 1990s declined over the decades to 0.54% and 0.19%, respectively, but was significant only for coronary artery disease.
  - The risk of coronary artery disease was significantly decreased from the 1970s, 1980s, and 1990s (0.38%, 0.24%, and 0.19%, respectively; HR, 0.65) and was attributed to historical reductions in exposure to cardiac radiation, particularly among survivors of Hodgkin lymphoma.
  - For patients treated in the 1990s, the 20-year cumulative incidence was 0.05% for valvular disease, 0.03% for pericardial disease, and 0.13% for arrhythmias. These numbers did not change over the eras (1970–1990).
3. In the CCSS, data from 24,214 5-year survivors diagnosed between 1970 and 1999 were used to assess the impacts of radiation therapy dose and exposed cardiac volume, select chemotherapeutic agents, and age at exposure on the risk of late-onset cardiac disease.[19]
  - The cumulative incidence of cardiac disease (any cardiac disease, coronary artery disease, and heart failure) 30 years from diagnosis was 4.8%. Male survivors were more likely to develop coronary artery disease and less likely to develop heart failure than were female survivors. Non-Hispanic Black survivors were more likely to develop any cardiac disease than were non-Hispanic White survivors.
  - Low-to-moderate radiation therapy doses (5.0–19.9 Gy) to large cardiac volumes (>50% of the heart) were associated with a 1.6-fold increased risk of cardiac disease compared with survivors who did not have any cardiac radiation therapy exposure.
  - High doses (>20 Gy) to small cardiac volumes (0.1%–29.9%) were associated with an elevated rate of cardiac disease compared with unexposed survivors.
  - A dose-response relationship was observed between anthracycline exposure and heart failure, with younger children (<13 years) at the greatest risk of heart failure after comparable dosing.
4. Another CCSS study evaluated radiation dose–response relationships for cardiac substructures and cardiac outcomes among 25,481 5-year survivors treated between 1970 to 1999. Of these survivors, 48.2% were exposed to radiation therapy.[20]
  - At a median age of 30 years, the cumulative incidence (35 years from diagnosis) was 3.9% (95% CI, 3.4%–4.3%) for coronary artery disease, 3.8% (95% CI, 3.4%–4.2%) for heart failure, 1.2% (95% CI, 1.0%–1.5%) for valvular disease, and 1.4% (95% CI, 1.1%–1.96%) for arrythmia.
  - Mean doses of 5 to 9.9 Gy to the whole heart did not increase the risk of any cardiac disease, whereas mean doses of 5 to 9.9 Gy to the right coronary artery (RR, 2.6; 95% CI, 1.6–4.1) and left ventricle (RR, 2.2; 95% CI, 1.3–3.7) increased the risk of coronary artery disease.
  - Mean doses of 5 to 9.9 Gy to the tricuspid valve (RR, 5.5; 95% CI, 2.0–15.1) and right ventricle (RR, 8.4; 95% CI, 3.7–19.0) increased the risk of valvular disease.
  - Statistical modeling suggested that any radiation to the cardiac substructures elevate the risk of cardiac diseases, and there is no threshold dose that can mitigate this risk.
5. A cross-sectional CCSS study included 571 adult-aged survivors of childhood cancer (median age, 37.7 years; 28.5 years from cancer diagnosis). The study compared rates of underdiagnosis and undertreatment of modifiable risk factors among survivors and respondents to the National Health and Nutrition Examination Survey (NHNES).[21]
  - Rates of cardiovascular disease risk factor underdiagnosis were similar (27.1% of survivors vs. 26.1% of participants from the NHNES; P = .73). However, survivors were more likely to be undertreated (21.0% versus 13.9%, P = .007; OR, 1.8; 95% CI, 1.2–2.7).
  - Hypertension (18.9%) and dyslipidemia (16.3%) represented the most underdiagnosed and undertreated risk factors.
  - Men and survivors who were overweight or had obesity were more likely to be underdiagnosed and undertreated.
  - These adult-aged childhood cancer survivors were nearly twice as likely to be undertreated for these conditions.
6. Dyslipidemia is more common and is an independent predictor of cardiovascular disease among survivors, compared with controls. Specific lipid abnormalities and the risk of atherosclerotic cardiovascular disease were investigated in 4,115 childhood cancer survivors from the SJLIFE cohort.[22]
  - Of this cohort, 3,406 survivors did not have a previous dyslipidemia diagnosis.
  - Low HDL cholesterol (HR, 2.9) and elevated triglycerides (HR, 3.1) were associated with an increased risk of myocardial infarction.
  - Diagnosis of high LDL cholesterol (HR, 2.2), high non-HDL cholesterol (HR, 2.2), low HDL cholesterol (HR, 3.9), and elevated triglycerides (HR, 3.8) were associated with an increased risk of cardiomyopathy.
7. A Dutch CCSS-LATER study evaluated the prevalence of and risk factors for hypertension in childhood cancer survivors (median age, 32.5 years; median follow-up, 25.5 years) who were treated with potentially nephrotoxic therapies.[23]
  - Survivors (16.3%) and controls (18.2%) had comparable rates of hypertension. Undiagnosed hypertension was prevalent in 12% of survivors and 17.8% of controls.
  - Treatment factors associated with risk of hypertension included abdominal radiation therapy of more than 20 Gy and total-body irradiation (TBI).
  - Among childhood cancer survivors, glomerular filtration rate (GFR) of less than 60 mL/min/1.73 m^2^ was significantly associated with hypertension (OR, 3.4; 95% CI, 1.4–8.5).
8. The CCSS demonstrated that the cumulative incidence of serious cardiac events (myocardial infarction, congestive heart failure, pericardial disease, and valvular abnormalities) in childhood cancer survivors continues to increase beyond age 45 years.[8]
  - The risk of these events was potentiated (i.e., beyond what would be expected by an additive model) by the presence of concurrent, but potentially modifiable, conditions such as obesity, dyslipidemia, diabetes, and, particularly, hypertension.
  - Hypertension was independently associated with all serious cardiac outcomes (rate ratios, 6-fold to 19-fold), even after adjustment for anthracycline use and chest irradiation.
9. Of 670 survivors of Hodgkin lymphoma who were treated at St. Jude Children’s Research Hospital (SJCRH) and survived 10 or more years, 348 patients were clinically assessed in the SJLIFE cohort study.[24]
  - Overall, survivors had a higher cumulative burden (a novel measurement of disease burden that incorporates multiple health conditions and recurrent events into a single metric) than community controls, with the total grade 3 to 5 cumulative burden among survivors at age 30 years being comparable with that of community controls at 50 years.
  - At age 50 years, the cumulative incidence of those survivors experiencing at least one grade 3 to grade 5 cardiovascular condition was 45.5% (95% CI, 36.6%–54.3%), compared with 15.7% (95% CI, 7.0%–24.4%) in community controls.
  - Myocardial infarction and structural heart defects were the major contributors to the excess grade 3 to grade 5 cumulative burden in survivors, whereas there was no notable difference in survivors and community controls at age 50 years for grades 3 to 5 cumulative burden of dyslipidemia and essential hypertension.
10. Another SJLIFE cohort study compared the prevalence of major and minor electrocardiography (ECG) abnormalities among 2,715 participants and 268 community controls.[25]
  - Major ECG abnormalities were significantly more prevalent in survivors (10.7%) than in controls (4.9%). The most common abnormalities included isolated ST-T wave abnormalities (7.2%), evidence of myocardial infarction (3.7%), and left ventricular hypertrophy with strain pattern (2.8%).
  - Treatment exposures predicting increased risk of major abnormalities were anthracycline doses of 300 mg/m^2^ or greater (OR, 1.7; 95% CI, 1.1–2.5) and cardiac radiation (OR, 2.1; 95% CI, 1.5–2.9 [0.01–19.99 Gy]; OR, 2.6; 95% CI, 1.6–3.9 [20–29.99 Gy]; OR, 10.5; 95% CI, 6.5–16.9 [≥30 Gy]).
  - Major ECG abnormalities were predictive of all-cause mortality (HR, 4.0; 95% CI, 2.1–7.8).
11. In the Teenage and Young Adult Cancer Survivor Study, cardiac mortality was investigated in more than 200,000 5-year survivors of adolescent and young adult cancer (aged 15–39 years).[3]
  - Age at diagnosis and type of cancer were identified as being important in determining risk of cardiac mortality.
  - The SMRs for all cardiac disease combined was greatest for individuals diagnosed at age 15 to 19 years (4.2), decreasing to 1.2 for individuals aged 35 to 39 years (2-sided P for trend < .0001). This age effect was most apparent for survivors of Hodgkin lymphoma, who were also found to be at greatest risk overall.
  - Limitations of this study included lack of detailed information on exposures to radiation therapy (doses, fields), exposures to chemotherapy (primarily anthracycline dose), and cardiovascular risk factors (e.g., smoking, obesity, hypertension, diabetes, family history).
12. Dutch investigators evaluated the risk of heart failure, temporal changes by treatment periods, and the risk factors for heart failure in 6,165 childhood cancer survivors (median age, 27.3 years; median follow-up, 19.8 years) diagnosed between 1963 and 2002.[26]
  - The cumulative incidence of developing a heart failure 40 years after a childhood cancer diagnosis was 4.4% (3.4%–5.5%) among cohort members.
  - The 20-year cumulative incidence of grade 3 or higher heart failure was greater among survivors treated in the more recent treatment periods (for survivors diagnosed between 1990 and 2001, 1.5%; between 1980 and 1989, 1.6%; and between 1970 and 1979, 0.5%) than in survivors treated earlier; however, mortality caused by heart failure decreased in the patients who were treated in the more recent periods.
  - Multivariable analysis demonstrated that patients who received higher doses of mitoxantrone or cyclophosphamide had an increased risk of heart failure compared with survivors who were exposed to lower doses.
13. The Pediatric Normal Tissue Effects in the Clinic (PENTEC) initiative reported on the risk of late cardiac disease for childhood cancer survivors who were treated with chemotherapy or radiation therapy.[27]
  - For each 10-Gy increase in corrected mean cardiac radiation dose in 1.8- to 2.0-Gy fractions, the estimated HRs were 2.01 (95% CI, 1.79–2.25) for coronary artery disease, 1.87 (95% CI, 1.70–2.06) for heart failure, 1.87 (95% CI, 1.78–1.96) for valvular disease, and 1.88 (95% CI, 1.75–2.03) for any cardiac disease.
  - For each 100-mg/m^2^ increase in cumulative anthracycline dose, the HR was 1.93 (95% CI, 1.58–2.36) for the development of heart failure, which is equivalent to an increase in mean heart radiation dose of approximately 10.5 Gy.

### Treatment Risk Factors

Chemotherapy (in particular, anthracyclines and anthraquinones) and radiation therapy, both independently and in combination, increase the risk of cardiovascular disease in survivors of childhood cancer and are considered to be the most important risk factors contributing to premature cardiovascular disease in this population.[3,10,17,28]

#### Anthracyclines and related agents

Anthracyclines (e.g., doxorubicin, daunorubicin, idarubicin, and epirubicin) and anthraquinones (e.g., mitoxantrone) are known to directly injure cardiomyocytes through inhibition of topoisomerase 2-beta in cardiomyocytes and formation of reactive oxygen species, resulting in activation of cell-death pathways and inhibition of mitochondrial apoptosis.[29,30] The downstream results of cell death are changes in heart structure, including wall thinning, which leads to ventricular overload and pathological remodeling that, over time, leads to dysfunction and eventual clinical heart failure.[31,32]

Risk factors for anthracycline-related cardiomyopathy include the following:[19,33]

- Cumulative dose, particularly greater than 250 to 300 mg/m^2^.
- Younger age at time of exposure, particularly children younger than 5 years.
- Increased time from exposure.
- While there is no definitive safe lower dose threshold, doses in excess of 250 to 300 mg/m^2^ have been associated with a substantially increased risk of cardiomyopathy, with cumulative incidences exceeding 5% after 20 years of follow-up, and in some subgroups, reaching or exceeding 10% cumulative incidence by age 40 years.[18,19,32]
- Concurrent chest or heart radiation therapy also further increases risk of cardiomyopathy,[10,28,34] as does the presence of other cardiometabolic traits such as hypertension.[8,35]
- While development of clinical heart failure can occur within a few years after anthracycline exposure, in most survivors—even those who received very high doses—clinical manifestations may not occur for decades.

##### Anthracycline dose equivalency

Traditionally, anthracycline dose equivalence has largely been based on acute hematologic toxicity equivalence rather than late cardiac toxicity.

- Analyses that pooled data from more than 28,000 long-term childhood cancer survivors monitored through age 40 years (resulting in 399 cardiomyopathy cases) have challenged previous assumptions that consider daunorubicin equivalent or nearly equivalent to doxorubicin.[36,37]
  - These investigations found that daunorubicin may be significantly less cardiotoxic than doxorubicin (equivalence ratio, 0.5; 95% CI, 0.4–0.7).[36]
  - Compared with doxorubicin, mitoxantrone may be significantly more cardiotoxic than previously thought (equivalence ratio, 10.5; 95% CI, 6.2–19.1), while epirubicin appeared to be doxorubicin isoequivalent (equivalence ratio, 0.8; 95% CI, 0.3–1.4).[37]
  - Data were too sparse to compare idarubicin with doxorubicin.

##### Anthracycline cardioprotection

Cardioprotective strategies that have been explored include the following:

- New, less cardiotoxic agents and liposomal formulations. In general, data on whether liposomal formulations of anthracyclines reduce cardiac toxicity in children are limited.[38,39]
- Prolonged infusion time. Prolonged infusion time has been associated with reduced heart failure in adult patients, but not in children.[40,41]
- Concurrent administration of cardioprotectants. A variety of agents have been tested as cardioprotectants (amifostine, acetylcysteine, calcium channel blockers, carvedilol, coenzyme Q10, and L-carnitine), but none were beneficial and are not considered standard of care.[42,43]
- Dexrazoxane. There are more data for dexrazoxane as a cardioprotectant, but mainly in adult patients with cancer. In particular, the U.S. Food and Drug Administration approved dexrazoxane for women with metastatic breast cancer who have received 300 mg/m^2^ of anthracyclines and who may benefit from further anthracycline-based therapy.[42]
  - Pediatric data show that dexrazoxane may ameliorate some markers of early cardiac toxicity for up to 5 years after therapy.[44-47]
  - Dexrazoxane may be associated with an increased risk of acute toxicities in some regimens.[48]
  - A long-term study assessed outcomes of newly diagnosed children with cancer who were treated with dexrazoxane-containing regimens in randomized clinical trials (cumulative prescribed doxorubicin dose, 100–360 mg/m^2^; median follow-up, 18.6 years). Dexrazoxane was not associated with cancer relapse (HR, 0.84; 95% CI, 0.63–1.13), second cancers (HR, 1.19; 95% CI, 0.62–2.30), all-cause mortality (HR, 1.07; 95% CI, 0.78–1.47), or cardiovascular mortality (HR, 1.45; 95% CI, 0.41–5.16).[49]
  - Another study evaluated long-term cardiac outcomes of 195 children with acute lymphoblastic leukemia or Hodgkin lymphoma who received doxorubicin with or without dexrazoxane in four randomized trials and patients with osteosarcoma who all received doxorubicin with dexrazoxane in a nonrandomized trial.[50]
    - At 18.1 years since cancer diagnosis (51% dexrazoxane exposed; cumulative doxorubicin dose, 297 mg/m^2^), dexrazoxane administration was associated with superior left ventricular fractional shortening (absolute difference, 1.4%; 95% CI, 0.3–2.5) and ejection fraction (absolute difference, 1.6%; 95% CI, 0.0–3.2) and lower myocardial stress per B-type natriuretic peptide (-6.7 pg/mL; 95% CI, -10.6 to -2.8).
    - Dexrazoxane use was associated with a reduced risk of lower left ventricular function (30% fractional shortening or 50% ejection fraction; OR, 0.24; 95% CI, 0.07–0.81), which was primarily observed in those treated with cumulative doxorubicin doses of 250 mg/m^2^ or higher.

#### Radiation therapy

While anthracyclines directly damage cardiomyocytes, radiation therapy primarily affects the fine vasculature of affected organs.[7]

##### Cardiovascular disease

Late effects of radiation therapy to the heart specifically include the following:

- Delayed pericarditis, which can present abruptly or as a chronic pericardial effusion.
- Pancarditis that includes pericardial and myocardial fibrosis, with or without endocardial fibroelastosis.
- Cardiomyopathy (in the absence of significant pericardial disease), which can occur even without anthracycline exposure.
- Ischemic heart disease.
- Functional valve injury, often aortic.
- Conduction defects.

These cardiac late effects are related to the following:

- Individual radiation fraction size.
- Volume of the heart that is exposed to radiation.[19,51]
- Total radiation dose.
  - Various studies have demonstrated a substantially increased risk of these outcomes with higher radiation doses, particularly doses to the heart exceeding 35 Gy.[10,12,18,19,28]
  - At higher radiation doses, rates of heart failure, pericardial disease, and valvular disease have been reported to exceed 10% after 20 to 30 years. Although some studies suggest that doses less than 5 Gy may be associated with an increased risk of cardiovascular disease, the relative risk is small (i.e., 2.5) and the 95% CI is large (i.e., 0.2–41.5); moreover, the dosimetric analyses are generally estimations of incidental cardiac exposure.[10,18,28]
  - Low to moderate doses of radiation therapy (5.0–19.9 Gy) to large cardiac volumes (>50% of the heart) are associated with an increased rate of cardiac disease (i.e., 1.6-fold) compared with survivors who did not have any cardiac radiation therapy exposure.[19]
  - High doses of radiation (>20 Gy) to small cardiac volumes (0.1%–29.9%) are associated with an elevated rate of cardiac disease (relative rate, 2.4).[19,52]
  - Additional confirmatory data are needed for an accurate assessment of risk at very low cardiac doses.
  - Similar to anthracyclines, manifestation of these late effects may take years, if not decades, to present.

Patients who were exposed to both radiation therapy affecting the cardiovascular system and cardiotoxic chemotherapy agents are at even greater risk of late cardiovascular outcomes.[10,19] This risk may be decreasing based on Children's Oncology Group (COG) Hodgkin lymphoma clinical trials spanning from 2002 to 2022.[53]

- In a cohort study of 2,563 patients with Hodgkin lymphoma treated in four consecutive COG clinical trials between 2002 and 2022 (AHOD0031, AHOD0831, AHOD1331, S1826), the cumulative incidence of grades 3 to 5 cardiac disease was estimated to decrease, from 10% in the first trial to 6% in the last trial.
- All patients received doxorubicin, 1,362 received mediastinal radiation therapy, and 307 received the cardioprotectant dexrazoxane (80% of children in the S1826 study). Radiation therapy was substantially reduced and refined, whereas the anthracycline doses were increased.
- Based on modeling used as part of this study, survivors treated in the recent high-risk Hodgkin lymphoma trial (S1826), the 30-year risk of serious cardiac morbidity will be increased less than 2% above the expected rate in an untreated population (5%). Reductions in the proportion of children receiving mediastinal radiation therapy and increases in dexrazoxane use were estimated to offset the increased doxorubicin dose, producing a net reduction in late cardiac disease.
- These results suggest that cardiac toxic effects are estimated to decrease from older to newer Hodgkin lymphoma trials, even in females aged 12 years and younger, who are most susceptible to anthracycline-induced heart failure.

##### Cerebrovascular disease

Cerebrovascular disease after radiation therapy exposure is another potential late effect observed in survivors.

- Radiation-induced vascular damage is a complex process that involves both arterial and capillary damage, with veins being less sensitive.
- The spectrum of abnormalities includes lacunar lesions, vascular malformations, telangiectasias, intracranial hemorrhage, moyamoya, microbleeds, and cavernomas, each with potential symptomatic consequences.[54,55]
- While brain tumor survivors have traditionally had the greatest risk, other survivors exposed to cranial irradiation (≥18 Gy) and neck irradiation (≥40 Gy), such as leukemia and lymphoma survivors, have also been reported to be at increased risk.[56-59]
- In a PENTEC analysis, risk of cerebrovascular toxicity and future risk of stroke were analyzed and modeled (COX proportional hazards and baseline cumulative incidences of stroke in nonradiation therapy exposed, age-matched cancer patients and the general population).[60]
  - Of 3,898 pediatric patients analyzed in five reports, 101 experienced at least one cerebrovascular toxicity (e.g., transient ischemic attack [TIA], stroke, moyamoya, or arteriopathy).
  - The risk of any cerebrovascular toxicity was 0.2% at 30 Gy, 1.3% at 45 Gy, and 4.4% at 54 Gy (D_50_, 75.6 Gy; 68.4–89.4 Gy).
  - At an attained age of 35 years, the predicted stroke incidence at d doses was 0.9% to 1.3% at 30 Gy, 1.8% to 2.7% at 45 Gy, and 2.8% to 4.1% at 54 Gy (population baseline risk, 0.2%–0.3%).
  - At an attained age of 45 years, the predicted stroke incidence was 2.1% to 4.2% at 30 Gy, 4.5% to 8.6% at 45 Gy, and 6.7% to 13.0% at 54 Gy (population baseline risk, 0.5%–1.0%).
  - Thus, the risk of future cerebrovascular toxicity continues to rise as follow-up duration increases. Additionally, because the stroke hazard was based on prescribed tumor bed dose rather than circle-of-Willis dose, the reported stroke risk was likely underestimated.
- In lymphoma survivors who received only chest and/or neck radiation therapy, cerebrovascular disease is thought to be caused by large-vessel atherosclerosis and cardiac embolism.[57]
- The risk increases with cumulative dose received. One study (N = 325) reported that the stroke hazard increased by 5% (HR, 1.05; 95% CI, 1.01–1.09; P = .02), with each 1 Gy increase in the radiation dose, leading to a cumulative incidence of 2% for the first stroke after 5 years and 4% after 10 years.[61]
- Survivors who experienced a stroke were at much greater risk of recurrent strokes.[62]

Evidence (selected studies describing prevalence of and risk factors for cerebrovascular accident [CVA]/vascular disease):

1. The population-based British Childhood Cancer Survivor Study (n = 13,457) used Hospital Episode Statistics data for England to assess the risk of cerebrovascular-related hospitalizations (e.g., nontraumatic intracranial hemorrhage, cerebral infarction, or cerebral artery occlusion), particularly in patients older than 50 years.[59]
  - They found that 2.3% of the survivors had been hospitalized at least once for cerebrovascular disease, with a fourfold risk compared with the expected rate.
  - Survivors of central nervous system (CNS) tumors or leukemia who received cranial irradiation were at greatest risk of cerebrovascular disease (CNS tumor standardized hospitalization ratio [SHR], 15.6; 95% CI, 14.0–17.4 and leukemia SHR, 5.4; 95% CI, 4.5–6.4).
  - Beyond age 60 years, on average, 3.1% of CNS tumor survivors treated with cranial irradiation were hospitalized annually for cerebrovascular disease. By age 65 years, as many as 26% of these patients will have been hospitalized for a cerebrovascular event.
2. CCSS investigators observed that 295 of 13,060 participants (35% treated with cranial radiation therapy) reported having a stroke (6.3%; 95% CI, 5.1%–7.5%) by age 50 years (median follow-up, 19 years). For survivors considered to be high risk, the cumulative incidence of cerebrovascular disease up to age 50 was 19.9%.[63]
3. A retrospective study of 3,172 5-year survivors of childhood cancer monitored for a mean time of 26 years was formed from the Euro2K cohort, which included eight centers in France and the United Kingdom. Radiation doses to the circle of Willis were estimated for each of the 2,202 children who received radiation therapy.[64]
  - Patients who received radiation therapy had an 8.5-fold increased risk (95% CI, 6.3–11.0) of stroke in contrast to a nonelevated risk for patients who did not receive radiation therapy.
  - The relative risk was 15.7 (95% CI, 4.9–50.2) for doses of 40 Gy or higher.
  - At age 45 years, the cumulative incidence was 11.3% (95% CI, 7.1%–17.7%) in patients who received 10 Gy or higher to the circle of Willis, compared with 1% in the general population.
4. Investigators from the Teenage and Young Adult Cancer Survivor Study (N = 178,962) evaluated the risk of hospitalization for a cerebrovascular event among 5-year survivors of cancer diagnosed between age 15 and 39 years.[65]
  - The investigators found that survivors of adolescent and young adult cancers had a 40% increased risk of hospitalization for cerebrovascular event compared with the general population.
  - Survivors of CNS tumors (SHR, 4.6), head and neck tumors (SHR, 2.6), and leukemia (SHR, 2.5) had the highest risk of hospitalization for a cerebrovascular complication.
  - Males had significantly higher absolute excess risks than did females, especially among head and neck tumor survivors. By age 60 years, 9% of CNS tumor survivors, 6% of head and neck tumor survivors, and 5% of leukemia survivors had been hospitalized for a cerebrovascular event.
  - The risk of hospitalization for a cerebral infarction was particularly increased among survivors of a CNS tumor older than 60 years, whereas this risk was increased across all ages in survivors of head and neck tumors.
5. CCSS investigators evaluated the rates and predictors of recurrent stroke among participants who reported a first stroke.[62]
  - Among responding participants (329 of 443), 271 confirmed a first stroke (at median age, 19 years) and 70 reported a second stroke (at median age, 32 years).
  - Independent predictors of recurrent stroke included treatment with a cranial radiation therapy dose of 50 Gy or higher (vs. no cranial radiation therapy), history of hypertension, and age 40 years or older at first stroke (vs. age 0–17 years).
  - The 10-year cumulative incidence of late recurrent stroke was 21% overall and 33% for those treated with 50 Gy or higher of cranial radiation therapy.
  - A follow-up study of 224 CCSS participants who experienced stroke demonstrated an increased risk of all-cause and health-related mortality and a negative impact on social attainment, neurocognitive function, emotional distress, and other health-related quality-of-life measures.[66]
6. A multicenter retrospective Dutch study evaluated 5-year survivors of Hodgkin lymphoma diagnosed before age 51 years (25% pediatric-aged patients) who were followed for a median of 18 years. Among 2,201 survivors, 96 developed cerebrovascular disease (CVA and TIA).[57]
  - Most ischemic events were from large-artery atherosclerosis (36%) or cardiac embolism (24%).
  - The cumulative incidence of ischemic CVA or TIA 30 years after lymphoma treatment was 7%.
  - The overall standardized incidence ratio (SIR) was 2.2 for CVA and 3.1 for TIA. However, SIR estimates appeared to be greater among childhood cancer survivors, with SIRs of 3.8 for CVA and 7.6 for TIA.
  - Irradiation to the neck and mediastinum was an independent risk factor for ischemic cerebrovascular disease (HR, 2.5; 95% CI, 1.1–5.6) versus no radiation therapy. Treatment with chemotherapy was not associated with increased risk.
  - Hypertension, diabetes mellitus, and hypercholesterolemia were associated with the occurrence of ischemic cerebrovascular disease.

##### Venous thromboembolism

Children with cancer have an excess risk of venous thromboembolism within the first 5 years after diagnosis. However, the long-term risk of venous thromboembolism among childhood cancer survivors has not been well studied.[67]

CCSS investigators evaluated self-reported late-onset (5 or more years after cancer diagnosis) venous thromboembolism among cohort members (median follow-up, 21.3 years).[68]

- The 35-year cumulative incidence of venous thromboembolism among survivors was 4.9%. This risk was twofold higher when compared with a sibling cohort (rate ratio, 2.2; 95% CI, 1.7–2.8).
- Risk factors for venous thromboembolism among survivors included female sex, treatment with cisplatin or asparaginase, being affected by obesity or underweight, and recurrent primary or subsequent cancer.
- The risk of late venous thromboembolism was higher among survivors of lower-extremity osteosarcoma treated with limb-sparing surgery compared with patients treated with amputation, possibly resulting from alterations in peripheral vascular anatomy and homeostasis.
- Venous thromboembolism was associated with an almost-twofold increased risk of late mortality (RR, 1.9; 95% CI, 1.6–2.3).

#### Conventional cardiovascular conditions

- Various cancer treatment exposures may also directly or indirectly influence the development of hypertension, diabetes mellitus, and dyslipidemia.
- These conditions remain important among cancer survivors, as they do in the general population, in that they are independent risk factors in the development of cardiomyopathy, ischemic heart disease, and cerebrovascular disease.[8,69-72]
- Childhood cancer survivors should be closely monitored for the development of these cardiovascular conditions because they represent potentially modifiable targets for intervention.
- Related conditions such as obesity and various endocrinopathies (e.g., hypothyroidism, hypogonadism, growth hormone deficiency) that may be more common among subsets of childhood cancer survivors also need to be monitored. If these conditions are untreated/uncontrolled, they may be associated with a metabolic profile that increases cardiovascular risk.[9] For more information, see the Risk prediction for cardiovascular diseases section.

### Other Risk Factors

- Sex. Some, but not all, studies suggest that female sex may be associated with a greater risk of anthracycline-related cardiomyopathy.[7]
- Genetics. There is emerging evidence that genetic factors, such as single nucleotide polymorphisms in genes regulating drug metabolism and distribution, could explain the heterogeneity in susceptibility to anthracycline-mediated cardiac injury.[73-81] However, these genetic findings still require additional validation before integration into any clinical screening algorithm.[81]

### Peripartum Cardiac Dysfunction

Long-term survivors of childhood, adolescent, and young adult malignancies with past exposure to potentially cardiotoxic treatments are at risk of peripartum cardiac dysfunction.

In the general population, peripartum cardiomyopathy (PPCM) is a rare condition characterized by heart failure during pregnancy (usually the last trimester or <5 months postpartum). The estimated incidence in the general population is 1 case per 3,000 live births.[82]

There are limited data available about the prevalence in survivors of pediatric, adolescent, and young adult malignancies who have received cardiotoxic therapies.

- In a retrospective series from SJCRH, 3 cases of peripartum cardiac dysfunction occurred in 1,554 completed pregnancies, which was an incidence of 0.2%; 27% of the 847 long-term survivors had not been exposed to cardiotoxic therapies.[83]
- In a series of 64 women who had all received cardiotoxic therapy (44% received chest radiation therapy plus anthracyclines, 14% received chest radiation therapy, 42% received anthracycline alone), 5 women (7.8%) had peripartum cardiac events (3 symptomatic, 2 subclinical). Of the 110 live births, 2 involved PPCM, representing a 55-fold increased risk over the general population. Risk factors were younger age at cancer diagnosis and higher anthracycline dose. Postpartum cardiac function failed to return to baseline in four women (80%).[84]
- A single-center study estimated the risk of developing congestive heart failure (CHF) during pregnancy as 1 out of 3 female cancer survivors with a history of cardiotoxicity.[85] Seventy-eight consecutive female cancer survivors previously exposed to potentially cardiotoxic treatments (chemotherapy and/or radiation therapy to the thorax as children, adolescents or young adults) who had 94 pregnancies were retrospectively identified through high-risk clinics between 2005 and 2015.
  - A total of 55 women received anthracyclines (range, 90–500 mg/m^2^), while 23 received nonanthracycline chemotherapy and/or radiation therapy only. Of the 13 women with prior cardiotoxicity, 8 had reduced left ventricular ejection fraction at the first antenatal visit. CHF occurred in five pregnancies (4 women; 5.3%).
  - The incidence of CHF was 31% for women with a history of cardiotoxicity and 0% for women without a history of cardiotoxicity. When comparing clinical characteristics between women with and without CHF, there was no difference in age of cancer diagnosis, cancer type, or exposure to anthracyclines.
  - Risk factors for developing CHF were history of cardiotoxicity before pregnancy, left ventricular systolic dysfunction at first antenatal visit, or receiving cardiac medications.

Based on available evidence about peripartum cardiomyopathy, the International Guideline Harmonization Group assessed that cardiomyopathy surveillance is reasonable before pregnancy or in the first trimester for female survivors of childhood, adolescent, and young adult cancer who are at moderate and high risk because they were treated with anthracyclines or chest radiation therapy.[33]

### Mortality Risk After Major Cardiovascular Events

Survivors of childhood cancer represent a population at high risk of mortality after major cardiovascular events. Investigators estimated the cumulative incidence of all-cause and cardiovascular cause–specific mortality among survivors from the CCSS who had experienced a major cardiovascular event and compared them to siblings. They also compared the outcomes from the CCSS cancer survivors with a population-based cohort of racially diverse adults from the Coronary Artery Risk Development in Young Adults (CARDIA) study.[86]

- Among the 25,658 childhood cancer survivors (median age at diagnosis, 7 years; median age at follow-up or death, 38 years) and 5,051 siblings, 1,780 survivors and 91 siblings experienced a cardiovascular event.
- The 10-year all-cause mortality rate for survivors was 30% after heart failure, 36% after cardiovascular artery disease, and 29% after stroke. The 10-year all-cause mortality rate for siblings was 14% after heart failure, 14% after coronary artery disease, and 4% after stroke (P < .001 for all survivors).
- All-cause mortality risks among childhood cancer survivors were increased after heart failure (HR, 7.32), coronary artery disease (HR, 5.54), and stroke (HR, 3.57).
- Among 5,114 CARDIA participants, 345 had a major event. CARDIA participants were, on average, decades older at events (median age, 57 years vs. 31 years). However, mortality risks were similar, except that all-cause mortality after coronary artery disease was significantly increased among childhood cancer survivors (HR, 1.85).

### Heart Transplant After Childhood Cancer

Data about the prevalence and outcomes of survivors with heart failure requiring heart transplant are limited.

- In a study of solid organ transplants in 13,318 survivors in the CCSS, 62 survivors had end-stage heart failure that warranted heart transplants, 37 of whom received a heart transplant.[87]
- At 35 years after cancer diagnosis, the cumulative incidence of heart transplant was 0.30%, and the cumulative incidence of being placed on the waiting list or receiving a heart was 0.49%.[87]
- The 5-year survival rate from heart transplant was 80.6%, which is similar to the outcome in the general population of the same age range.[87]

### Knowledge Deficits

While much knowledge has been gained over the past 20 years in better understanding the long-term burden and risk factors for cardiovascular disease among childhood cancer survivors, many areas of inquiry remain, and include the following:

- Radiation may have both direct and indirect effects on vascular endothelium, contributing to vascular damage beyond the primary radiation field.[88]
- The long-term effects of lower radiation doses, particularly in the setting of advanced technology that allows tumor targeting from multiple directions and reduces exposure to surrounding normal tissues, remain to be determined.[89]
- The long-term effects of many newer anticancer agents that are based on molecular targets remain unclear, although some of them are known to have shorter-term cardiac toxicity.[16]
- The efficacy of cardioprotective strategies, including the use of alternative anthracycline formulations that appear promising in adults, requires further study in children.[43]

### Screening, Surveillance, and Counseling

The International Guideline Harmonization Group has worked collaboratively to harmonize evidence-based cardiac surveillance recommendations and have identified knowledge deficits to help guide future studies.[33,72] Risk groups defined by cumulative exposures of anthracycline and chest-directed radiation therapy as well as cardiomyopathy surveillance recommendations are summarized in Table 2.

#### Consensus regarding evidence about screening, surveillance, and counseling

- There is no clear evidence (at least through age 50 years or 30–40 years posttreatment) that a plateau in risk occurs after a certain time among survivors exposed to cancer treatments associated with cardiovascular late effects.[90,91] Thus, life-long surveillance is recommended by one group, even if the cost-effectiveness of certain screening strategies remains unclear.[33,92-94]
  Table 2. Risk Groups and Cardiomyopathy Surveillance Recommendations for Survivors of Childhood, Adolescent, and Young Adult Cancer^a^
  Risk Group | Anthracycline (mg/m^2^) | Chest-Directed Radiation Therapy (Gy) | Anthracycline (mg/m^2^) + Chest-Directed Radiation Therapy (Gy) | Is Screening Recommended? | At What Interval?
  High risk | ≥250 | ≥30 | ≥100 and ≥15 | Yes | 2 years
  Moderate risk | 100 to <250 | 15 to <30 | NA | Maybe | 5 years
  Low risk | >0 to <100 | >0 to <15 | NA | No | No screening
  NA = not applicable.
  ^a^Adapted from Ehrhardt et al.[33]
- A growing body of literature is beginning to establish the yield from these screening studies, which will help inform future guidelines.[9,95-97] In these studies, for example, among adult-aged survivors of childhood cancer, evidence for cardiomyopathy on the basis of echocardiographic changes was found in approximately 6% of at-risk survivors. Overall, in a cohort of more than 1,000 survivors (median age, 32 years), nearly 60% of screened at-risk survivors had some clinically ascertained cardiac abnormality identified.[9]
- Given the growing evidence that conventional cardiovascular conditions such as hypertension, dyslipidemia, and diabetes substantially increase the risk of more serious cardiovascular disease among survivors, clinicians should carefully consider baseline and follow-up screening and treatment of these comorbid conditions that impact cardiovascular health (see Table 3).[8,57,69,98]
- There is also emerging evidence that adoption of healthier lifestyle factors may decrease future cardiovascular morbidity in at-risk survivors.[99,100] Thus, similar to the general population, survivors should be counseled about maintaining a healthy weight, participating in regular physical activity, adhering to a heart-healthy diet, and abstaining from smoking.
- The COG has organized handouts on cardiovascular disease and related topics, including lifestyle choices, written for a lay audience to facilitate counseling and education of survivors. For more information, see the COG Survivorship Guidelines (http://www.survivorshipguidelines.org/).

### Predicting Cardiovascular Disease Risk

- Attempts to develop more individualized risk prediction for cardiovascular disease may help refine surveillance and counseling in the future.
- Several groups have collaborated to develop and validate individualized risk calculators for heart failure, ischemic heart disease, and stroke through age 50 years.[34,63,98]
- Updated models based only on CCSS data have incorporated hypertension, dyslipidemia, and diabetes status across time to further refine prediction.[98]
- An online risk calculator incorporating these models is available on the CCSS website (https://ccss.stjude.org/cvcalc).

#### Risk prediction and interventions for cardiovascular diseases

- Using data from four large, well-annotated childhood cancer survivor cohorts (CCSS, National Wilms Tumor Study Group, the Netherlands, and SJCRH), a heart failure risk calculator based on readily available demographic and treatment characteristics has been created and validated. This calculator may provide more individualized clinical heart failure risk estimation for 5-year survivors of childhood cancer who have recently completed therapy, through age 40 years. Because of the young age of participants at the time of baseline prediction (5-year survival), this estimator is limited in that information on conventional cardiovascular conditions such as hypertension, dyslipidemia, or diabetes could not be incorporated.[34]
- In another collaborative study, data from the CCSS, Netherlands, and SJCRH were used to develop risk-prediction models for ischemic heart disease and stroke among 5-year survivors of childhood cancer through age 50 years. Risk scores derived from a standard prediction model that included sex, chemotherapy exposure, and radiation therapy exposure identified statistically distinct low-risk, moderate-risk, and high-risk groups. The cumulative incidences at age 50 years among CCSS low-risk groups were less than 5%, compared with approximately 20% for high-risk groups and only 1% for siblings.[63]
- Traditional cardiovascular risk factors remain important for predicting risk of cardiovascular disease among adult-aged survivors of childhood cancer. This finding was demonstrated by a CCSS investigation that constructed prediction models accounting for cardiotoxic cancer treatment exposures, combined with information on traditional cardiovascular risk factors such as hypertension, dyslipidemia, and diabetes. Risk scores based on demographic, cancer treatment, hypertension, dyslipidemia, and diabetes information showed good performance (area under the receiver operating characteristic curve and concordance statistics ≥0.70) for predicting cardiovascular events in the models applied to the discovery and replication cohorts. The most influential exposures were anthracycline chemotherapy, radiation therapy, diabetes, and hypertension.[98]
- Physical activity has been shown to be a safe intervention against the high burden of cardiovascular late effects in childhood cancer survivors. A randomized controlled trial investigated the effect of a partially supervised, personalized, 1-year physical activity intervention on cardiovascular health in long-term survivors of childhood cancer.[101] There were 151 childhood cancer survivors randomly assigned (1:1) to either perform more than 2.5 hours of additional intense physical activity per week (intervention group) or continue exercise as usual (control group). A significant and robust reduction of the cardiovascular disease risk score was noted at 6 months and 12 months in the intervention group, compared with the control group. The difference in the reduction of the cardiovascular disease risk z-score of -0.18 (P = .003) at 12 months favored the intervention group.

Table 3. Cardiovascular Late Effects^a,b^

Predisposing Therapy | Potential Cardiovascular Effects | Health Screening
Any anthracycline and/or any radiation exposing the heart | Cardiac toxicity (arrhythmia, cardiomyopathy/heart failure, pericardial disease, valve disease, ischemic heart disease) | Yearly medical history and physical examination
Any anthracycline and/or any radiation exposing the heart | Cardiac toxicity (arrhythmia, cardiomyopathy/heart failure, pericardial disease, valve disease, ischemic heart disease) | Electrocardiography at entry into long-term follow-up
Any anthracycline and/or any radiation exposing the heart | Cardiac toxicity (arrhythmia, cardiomyopathy/heart failure, pericardial disease, valve disease, ischemic heart disease) | Echocardiography at entry into long-term follow-up, periodically repeat based on previous exposures and other risk factors
Radiation exposing the neck and base of skull (especially ≥40 Gy) | Carotid and/or subclavian artery disease | Yearly medical history and physical examination; consider Doppler ultrasonography 10 years after exposure
Radiation exposing the brain/cranium (especially ≥18 Gy) | Cerebrovascular disease (cavernomas, moyamoya, occlusive cerebral vasculopathy, stroke) | Yearly medical history and physical examination
Radiation exposing the abdomen | Diabetes | Diabetes screening every 2 years
Total-body irradiation (usually <14 Gy) | Dyslipidemia; diabetes | Fasting lipid profile and diabetes screening every 2 years
Heavy metals (carboplatin, cisplatin), and ifosfamide exposure; radiation exposing the kidneys; HSCT; nephrectomy | Hypertension (from renal toxicity) | Yearly blood pressure test; renal function laboratory studies at entry into long-term follow-up and repeat as clinically indicated
HSCT = hematopoietic stem cell transplant.

^a^The Children's Oncology Group (COG) guidelines also cover other conditions that may influence cardiovascular risk, such as obesity and diabetes mellitus/impaired glucose metabolism.

^b^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### References

Armstrong GT, Chen Y, Yasui Y, et al.: Reduction in Late Mortality among 5-Year Survivors of Childhood Cancer. N Engl J Med 374 (9): 833-42, 2016.26761625
Fidler MM, Reulen RC, Winter DL, et al.: Long term cause specific mortality among 34 489 five year survivors of childhood cancer in Great Britain: population based cohort study. BMJ 354: i4351, 2016.27586237
Henson KE, Reulen RC, Winter DL, et al.: Cardiac Mortality Among 200 000 Five-Year Survivors of Cancer Diagnosed at 15 to 39 Years of Age: The Teenage and Young Adult Cancer Survivor Study. Circulation 134 (20): 1519-1531, 2016.27821538
Suh E, Stratton KL, Leisenring WM, et al.: Late mortality and chronic health conditions in long-term survivors of early-adolescent and young adult cancers: a retrospective cohort analysis from the Childhood Cancer Survivor Study. Lancet Oncol 21 (3): 421-435, 2020.32066543
Hammoud RA, Liu Q, Dixon SB, et al.: The burden of cardiovascular disease and risk for subsequent major adverse cardiovascular events in survivors of childhood cancer: a prospective, longitudinal analysis from the St Jude Lifetime Cohort Study. Lancet Oncol 25 (6): 811-822, 2024.38821086
Fidler MM, Reulen RC, Henson K, et al.: Population-Based Long-Term Cardiac-Specific Mortality Among 34 489 Five-Year Survivors of Childhood Cancer in Great Britain. Circulation 135 (10): 951-963, 2017.28082386
Bansal N, Blanco JG, Sharma UC, et al.: Cardiovascular diseases in survivors of childhood cancer. Cancer Metastasis Rev 39 (1): 55-68, 2020.32026204
Armstrong GT, Oeffinger KC, Chen Y, et al.: Modifiable risk factors and major cardiac events among adult survivors of childhood cancer. J Clin Oncol 31 (29): 3673-80, 2013.24002505
Hudson MM, Ness KK, Gurney JG, et al.: Clinical ascertainment of health outcomes among adults treated for childhood cancer. JAMA 309 (22): 2371-81, 2013.23757085
Haddy N, Diallo S, El-Fayech C, et al.: Cardiac Diseases Following Childhood Cancer Treatment: Cohort Study. Circulation 133 (1): 31-8, 2016.26487757
Cotton CA, Peterson S, Norkool PA, et al.: Early and late mortality after diagnosis of wilms tumor. J Clin Oncol 27 (8): 1304-9, 2009.19139431
Schellong G, Riepenhausen M, Bruch C, et al.: Late valvular and other cardiac diseases after different doses of mediastinal radiotherapy for Hodgkin disease in children and adolescents: report from the longitudinal GPOH follow-up project of the German-Austrian DAL-HD studies. Pediatr Blood Cancer 55 (6): 1145-52, 2010.20734400
Green DM, Kun LE, Matthay KK, et al.: Relevance of historical therapeutic approaches to the contemporary treatment of pediatric solid tumors. Pediatr Blood Cancer 60 (7): 1083-94, 2013.23418018
Hudson MM, Neglia JP, Woods WG, et al.: Lessons from the past: opportunities to improve childhood cancer survivor care through outcomes investigations of historical therapeutic approaches for pediatric hematological malignancies. Pediatr Blood Cancer 58 (3): 334-43, 2012.22038641
de Baat EC, van Dalen EC, Mulder RL, et al.: Primary cardioprotection with dexrazoxane in patients with childhood cancer who are expected to receive anthracyclines: recommendations from the International Late Effects of Childhood Cancer Guideline Harmonization Group. Lancet Child Adolesc Health 6 (12): 885-894, 2022.36174614
Chow EJ, Antal Z, Constine LS, et al.: New Agents, Emerging Late Effects, and the Development of Precision Survivorship. J Clin Oncol 36 (21): 2231-2240, 2018.29874142
de Baat EC, Feijen EAM, Reulen RC, et al.: Risk Factors for Heart Failure Among Pan-European Childhood Cancer Survivors: A PanCareSurFup and ProCardio Cohort and Nested Case-Control Study. J Clin Oncol 41 (1): 96-106, 2023.36075007
Mulrooney DA, Hyun G, Ness KK, et al.: Major cardiac events for adult survivors of childhood cancer diagnosed between 1970 and 1999: report from the Childhood Cancer Survivor Study cohort. BMJ 368: l6794, 2020.31941657
Bates JE, Howell RM, Liu Q, et al.: Therapy-Related Cardiac Risk in Childhood Cancer Survivors: An Analysis of the Childhood Cancer Survivor Study. J Clin Oncol 37 (13): 1090-1101, 2019.30860946
Bates JE, Shrestha S, Liu Q, et al.: Cardiac Substructure Radiation Dose and Risk of Late Cardiac Disease in Survivors of Childhood Cancer: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 41 (22): 3826-3838, 2023.37307512
Chow EJ, Chen Y, Armstrong GT, et al.: Underdiagnosis and Undertreatment of Modifiable Cardiovascular Risk Factors Among Survivors of Childhood Cancer. J Am Heart Assoc 11 (12): e024735, 2022.35674343
Goldberg JF, Hyun G, Ness KK, et al.: Dyslipidemia and cardiovascular disease among childhood cancer survivors: a St. Jude Lifetime Cohort report. J Natl Cancer Inst 116 (3): 408-420, 2024.37952244
Kooijmans ECM, van der Pal HJH, Pluijm SMF, et al.: Hypertension in long-term childhood cancer survivors after treatment with potentially nephrotoxic therapy; DCCSS-LATER 2: Renal study. Eur J Cancer 172: 287-299, 2022.35810554
Bhakta N, Liu Q, Yeo F, et al.: Cumulative burden of cardiovascular morbidity in paediatric, adolescent, and young adult survivors of Hodgkin's lymphoma: an analysis from the St Jude Lifetime Cohort Study. Lancet Oncol 17 (9): 1325-34, 2016.27470081
Mulrooney DA, Soliman EZ, Ehrhardt MJ, et al.: Electrocardiographic abnormalities and mortality in aging survivors of childhood cancer: A report from the St Jude Lifetime Cohort Study. Am Heart J 189: 19-27, 2017.28625376
Feijen EAML, Font-Gonzalez A, Van der Pal HJH, et al.: Risk and Temporal Changes of Heart Failure Among 5-Year Childhood Cancer Survivors: a DCOG-LATER Study. J Am Heart Assoc 8 (1): e009122, 2019.30595059
Bates JE, Rancati T, Keshavarz H, et al.: Cardiac Disease in Childhood Cancer Survivors Treated With Radiation Therapy: A PENTEC Comprehensive Review. Int J Radiat Oncol Biol Phys 119 (2): 522-532, 2024.37061912
van der Pal HJ, van Dalen EC, van Delden E, et al.: High risk of symptomatic cardiac events in childhood cancer survivors. J Clin Oncol 30 (13): 1429-37, 2012.22473161
Zhang S, Liu X, Bawa-Khalfe T, et al.: Identification of the molecular basis of doxorubicin-induced cardiotoxicity. Nat Med 18 (11): 1639-42, 2012.23104132
Lyu YL, Kerrigan JE, Lin CP, et al.: Topoisomerase IIbeta mediated DNA double-strand breaks: implications in doxorubicin cardiotoxicity and prevention by dexrazoxane. Cancer Res 67 (18): 8839-46, 2007.17875725
Hudson MM, Rai SN, Nunez C, et al.: Noninvasive evaluation of late anthracycline cardiac toxicity in childhood cancer survivors. J Clin Oncol 25 (24): 3635-43, 2007.17704413
van der Pal HJ, van Dalen EC, Hauptmann M, et al.: Cardiac function in 5-year survivors of childhood cancer: a long-term follow-up study. Arch Intern Med 170 (14): 1247-55, 2010.20660845
Ehrhardt MJ, Leerink JM, Mulder RL, et al.: Systematic review and updated recommendations for cardiomyopathy surveillance for survivors of childhood, adolescent, and young adult cancer from the International Late Effects of Childhood Cancer Guideline Harmonization Group. Lancet Oncol 24 (3): e108-e120, 2023.37052966
Chow EJ, Chen Y, Kremer LC, et al.: Individual prediction of heart failure among childhood cancer survivors. J Clin Oncol 33 (5): 394-402, 2015.25287823
Armenian SH, Sun CL, Vase T, et al.: Cardiovascular risk factors in hematopoietic cell transplantation survivors: role in development of subsequent cardiovascular disease. Blood 120 (23): 4505-12, 2012.23034279
Feijen EA, Leisenring WM, Stratton KL, et al.: Equivalence Ratio for Daunorubicin to Doxorubicin in Relation to Late Heart Failure in Survivors of Childhood Cancer. J Clin Oncol 33 (32): 3774-80, 2015.26304888
Feijen EAM, Leisenring WM, Stratton KL, et al.: Derivation of Anthracycline and Anthraquinone Equivalence Ratios to Doxorubicin for Late-Onset Cardiotoxicity. JAMA Oncol 5 (6): 864-871, 2019.30703192
van Dalen EC, Michiels EM, Caron HN, et al.: Different anthracycline derivates for reducing cardiotoxicity in cancer patients. Cochrane Database Syst Rev (5): CD005006, 2010.20464735
Krauss AC, Gao X, Li L, et al.: FDA Approval Summary: (Daunorubicin and Cytarabine) Liposome for Injection for the Treatment of Adults with High-Risk Acute Myeloid Leukemia. Clin Cancer Res 25 (9): 2685-2690, 2019.30541745
van Dalen EC, van der Pal HJ, Caron HN, et al.: Different dosage schedules for reducing cardiotoxicity in cancer patients receiving anthracycline chemotherapy. Cochrane Database Syst Rev (4): CD005008, 2009.19821337
Lipshultz SE, Giantris AL, Lipsitz SR, et al.: Doxorubicin administration by continuous infusion is not cardioprotective: the Dana-Farber 91-01 Acute Lymphoblastic Leukemia protocol. J Clin Oncol 20 (6): 1677-82, 2002.11896119 21893336
Hensley ML, Hagerty KL, Kewalramani T, et al.: American Society of Clinical Oncology 2008 clinical practice guideline update: use of chemotherapy and radiation therapy protectants. J Clin Oncol 27 (1): 127-45, 2009.19018081
van Dalen EC, Caron HN, Dickinson HO, et al.: Cardioprotective interventions for cancer patients receiving anthracyclines. Cochrane Database Syst Rev (6): CD003917, 2011.21678342
Wexler LH, Andrich MP, Venzon D, et al.: Randomized trial of the cardioprotective agent ICRF-187 in pediatric sarcoma patients treated with doxorubicin. J Clin Oncol 14 (2): 362-72, 1996.8636745
Lipshultz SE, Scully RE, Lipsitz SR, et al.: Assessment of dexrazoxane as a cardioprotectant in doxorubicin-treated children with high-risk acute lymphoblastic leukaemia: long-term follow-up of a prospective, randomised, multicentre trial. Lancet Oncol 11 (10): 950-61, 2010.20850381
Asselin BL, Devidas M, Chen L, et al.: Cardioprotection and Safety of Dexrazoxane in Patients Treated for Newly Diagnosed T-Cell Acute Lymphoblastic Leukemia or Advanced-Stage Lymphoblastic Non-Hodgkin Lymphoma: A Report of the Children's Oncology Group Randomized Trial Pediatric Oncology Group 9404. J Clin Oncol 34 (8): 854-62, 2016.26700126
Shaikh F, Dupuis LL, Alexander S, et al.: Cardioprotection and Second Malignant Neoplasms Associated With Dexrazoxane in Children Receiving Anthracycline Chemotherapy: A Systematic Review and Meta-Analysis. J Natl Cancer Inst 108 (4): , 2016.26598513
Schwartz CL, Constine LS, Villaluna D, et al.: A risk-adapted, response-based approach using ABVE-PC for children and adolescents with intermediate- and high-risk Hodgkin lymphoma: the results of P9425. Blood 114 (10): 2051-9, 2009.19584400
Chow EJ, Aplenc R, Vrooman LM, et al.: Late health outcomes after dexrazoxane treatment: A report from the Children's Oncology Group. Cancer 128 (4): 788-796, 2022.34644414
Chow EJ, Aggarwal S, Doody DR, et al.: Dexrazoxane and Long-Term Heart Function in Survivors of Childhood Cancer. J Clin Oncol 41 (12): 2248-2257, 2023.36669148
Mansouri I, Allodji RS, Hill C, et al.: The role of irradiated heart and left ventricular volumes in heart failure occurrence after childhood cancer. Eur J Heart Fail 21 (4): 509-518, 2019.30592114
Shrestha S, Bates JE, Liu Q, et al.: Radiation therapy related cardiac disease risk in childhood cancer survivors: Updated dosimetry analysis from the Childhood Cancer Survivor Study. Radiother Oncol 163: 199-208, 2021.34454975
Lo AC, Liu A, Liu Q, et al.: Late Cardiac Toxic Effects Associated With Treatment Protocols for Hodgkin Lymphoma in Children. JAMA Netw Open 7 (1): e2351062, 2024.38241048
Murphy ES, Xie H, Merchant TE, et al.: Review of cranial radiotherapy-induced vasculopathy. J Neurooncol 122 (3): 421-9, 2015.25670390
Passos J, Nzwalo H, Valente M, et al.: Microbleeds and cavernomas after radiotherapy for paediatric primary brain tumours. J Neurol Sci 372: 413-416, 2017.27856004
Bowers DC, Liu Y, Leisenring W, et al.: Late-occurring stroke among long-term survivors of childhood leukemia and brain tumors: a report from the Childhood Cancer Survivor Study. J Clin Oncol 24 (33): 5277-82, 2006.17088567
De Bruin ML, Dorresteijn LD, van't Veer MB, et al.: Increased risk of stroke and transient ischemic attack in 5-year survivors of Hodgkin lymphoma. J Natl Cancer Inst 101 (13): 928-37, 2009.19535773
van Dijk IW, van der Pal HJ, van Os RM, et al.: Risk of Symptomatic Stroke After Radiation Therapy for Childhood Cancer: A Long-Term Follow-Up Cohort Analysis. Int J Radiat Oncol Biol Phys 96 (3): 597-605, 2016.27325477
Reulen RC, Guha J, Bright CJ, et al.: Risk of cerebrovascular disease among 13 457 five-year survivors of childhood cancer: A population-based cohort study. Int J Cancer 148 (3): 572-583, 2021.32683688
Waxer JF, Wong K, Modiri A, et al.: Risk of Cerebrovascular Events Among Childhood and Adolescent Patients Receiving Cranial Radiation Therapy: A PENTEC Normal Tissue Outcomes Comprehensive Review. Int J Radiat Oncol Biol Phys 119 (2): 417-430, 2024.36057476
Mueller S, Sear K, Hills NK, et al.: Risk of first and recurrent stroke in childhood cancer survivors treated with cranial and cervical radiation therapy. Int J Radiat Oncol Biol Phys 86 (4): 643-8, 2013.23623405
Fullerton HJ, Stratton K, Mueller S, et al.: Recurrent stroke in childhood cancer survivors. Neurology 85 (12): 1056-64, 2015.26311747
Chow EJ, Chen Y, Hudson MM, et al.: Prediction of Ischemic Heart Disease and Stroke in Survivors of Childhood Cancer. J Clin Oncol 36 (1): 44-52, 2018.29095680
El-Fayech C, Haddy N, Allodji RS, et al.: Cerebrovascular Diseases in Childhood Cancer Survivors: Role of the Radiation Dose to Willis Circle Arteries. Int J Radiat Oncol Biol Phys 97 (2): 278-286, 2017.28068236
Bright CJ, Hawkins MM, Guha J, et al.: Risk of Cerebrovascular Events in 178 962 Five-Year Survivors of Cancer Diagnosed at 15 to 39 Years of Age: The TYACSS (Teenage and Young Adult Cancer Survivor Study). Circulation 135 (13): 1194-1210, 2017.28122884
Mueller S, Kline CN, Buerki RA, et al.: Stroke impact on mortality and psychologic morbidity within the Childhood Cancer Survivor Study. Cancer 126 (5): 1051-1059, 2020.31809558
Walker AJ, Grainge MJ, Card TR, et al.: Venous thromboembolism in children with cancer - a population-based cohort study. Thromb Res 133 (3): 340-4, 2014.24388573
Madenci AL, Weil BR, Liu Q, et al.: Long-Term Risk of Venous Thromboembolism in Survivors of Childhood Cancer: A Report From the Childhood Cancer Survivor Study. J Clin Oncol : JCO2018784595, 2018.30216123
Mueller S, Fullerton HJ, Stratton K, et al.: Radiation, atherosclerotic risk factors, and stroke risk in survivors of pediatric cancer: a report from the Childhood Cancer Survivor Study. Int J Radiat Oncol Biol Phys 86 (4): 649-55, 2013.23680033
Chao C, Xu L, Bhatia S, et al.: Cardiovascular Disease Risk Profiles in Survivors of Adolescent and Young Adult (AYA) Cancer: The Kaiser Permanente AYA Cancer Survivors Study. J Clin Oncol 34 (14): 1626-33, 2016.26951318
Winther JF, Bhatia S, Cederkvist L, et al.: Risk of cardiovascular disease among Nordic childhood cancer survivors with diabetes mellitus: A report from adult life after childhood cancer in Scandinavia. Cancer 124 (22): 4393-4400, 2018.30307617
van Dalen EC, Mulder RL, Suh E, et al.: Coronary artery disease surveillance among childhood, adolescent and young adult cancer survivors: A systematic review and recommendations from the International Late Effects of Childhood Cancer Guideline Harmonization Group. Eur J Cancer 156: 127-137, 2021.34450551
Lipshultz SE, Lipsitz SR, Kutok JL, et al.: Impact of hemochromatosis gene mutations on cardiac status in doxorubicin-treated survivors of childhood high-risk leukemia. Cancer 119 (19): 3555-62, 2013.23861158
Visscher H, Ross CJ, Rassekh SR, et al.: Validation of variants in SLC28A3 and UGT1A6 as genetic markers predictive of anthracycline-induced cardiotoxicity in children. Pediatr Blood Cancer 60 (8): 1375-81, 2013.23441093
Wang X, Liu W, Sun CL, et al.: Hyaluronan synthase 3 variant and anthracycline-related cardiomyopathy: a report from the children's oncology group. J Clin Oncol 32 (7): 647-53, 2014.24470002
Wang X, Sun CL, Quiñones-Lombraña A, et al.: CELF4 Variant and Anthracycline-Related Cardiomyopathy: A Children's Oncology Group Genome-Wide Association Study. J Clin Oncol 34 (8): 863-70, 2016.26811534
Aminkeng F, Bhavsar AP, Visscher H, et al.: A coding variant in RARG confers susceptibility to anthracycline-induced cardiotoxicity in childhood cancer. Nat Genet 47 (9): 1079-84, 2015.26237429
Visscher H, Rassekh SR, Sandor GS, et al.: Genetic variants in SLC22A17 and SLC22A7 are associated with anthracycline-induced cardiotoxicity in children. Pharmacogenomics 16 (10): 1065-76, 2015.26230641
Singh P, Wang X, Hageman L, et al.: Association of GSTM1 null variant with anthracycline-related cardiomyopathy after childhood cancer-A Children's Oncology Group ALTE03N1 report. Cancer 126 (17): 4051-4058, 2020.32413235
Sapkota Y, Ehrhardt MJ, Qin N, et al.: A Novel Locus on 6p21.2 for Cancer Treatment-Induced Cardiac Dysfunction Among Childhood Cancer Survivors. J Natl Cancer Inst 114 (8): 1109-1116, 2022.35698272
Davies SM: Getting to the heart of the matter. J Clin Oncol 30 (13): 1399-400, 2012.22473154
Lewey J, Haythe J: Cardiomyopathy in pregnancy. Semin Perinatol 38 (5): 309-17, 2014.25037522
Hines MR, Mulrooney DA, Hudson MM, et al.: Pregnancy-associated cardiomyopathy in survivors of childhood cancer. J Cancer Surviv 10 (1): 113-21, 2016.26044903
Chait-Rubinek L, Mariani JA, Goroncy N, et al.: A Retrospective Evaluation of Risk of Peripartum Cardiac Dysfunction in Survivors of Childhood, Adolescent and Young Adult Malignancies. Cancers (Basel) 11 (8): , 2019.31344922
Liu S, Aghel N, Belford L, et al.: Cardiac Outcomes in Pregnant Women With Treated Cancer. J Am Coll Cardiol 72 (17): 2087-2089, 2018.30336834
Bottinor W, Im C, Doody DR, et al.: Mortality After Major Cardiovascular Events in Survivors of Childhood Cancer. J Am Coll Cardiol 83 (8): 827-838, 2024.38383098
Dietz AC, Seidel K, Leisenring WM, et al.: Solid organ transplantation after treatment for childhood cancer: a retrospective cohort analysis from the Childhood Cancer Survivor Study. Lancet Oncol 20 (10): 1420-1431, 2019.31471158
Brouwer CA, Postma A, Hooimeijer HL, et al.: Endothelial damage in long-term survivors of childhood cancer. J Clin Oncol 31 (31): 3906-13, 2013.24062395
Maraldo MV, Jørgensen M, Brodin NP, et al.: The impact of involved node, involved field and mantle field radiotherapy on estimated radiation doses and risk of late effects for pediatric patients with Hodgkin lymphoma. Pediatr Blood Cancer 61 (4): 717-22, 2014.24660228
Tukenova M, Guibout C, Oberlin O, et al.: Role of cancer treatment in long-term overall and cardiovascular mortality after childhood cancer. J Clin Oncol 28 (8): 1308-15, 2010.20142603
Armstrong GT, Kawashima T, Leisenring W, et al.: Aging and risk of severe, disabling, life-threatening, and fatal events in the childhood cancer survivor study. J Clin Oncol 32 (12): 1218-27, 2014.24638000
Chen AB, Punglia RS, Kuntz KM, et al.: Cost effectiveness and screening interval of lipid screening in Hodgkin's lymphoma survivors. J Clin Oncol 27 (32): 5383-9, 2009.19752333
Wong FL, Bhatia S, Landier W, et al.: Cost-effectiveness of the children's oncology group long-term follow-up screening guidelines for childhood cancer survivors at risk for treatment-related heart failure. Ann Intern Med 160 (10): 672-83, 2014.24842414
Yeh JM, Nohria A, Diller L: Routine echocardiography screening for asymptomatic left ventricular dysfunction in childhood cancer survivors: a model-based estimation of the clinical and economic effects. Ann Intern Med 160 (10): 661-71, 2014.24842413
Landier W, Armenian SH, Lee J, et al.: Yield of screening for long-term complications using the children's oncology group long-term follow-up guidelines. J Clin Oncol 30 (35): 4401-8, 2012.23091100
Ramjaun A, AlDuhaiby E, Ahmed S, et al.: Echocardiographic Detection of Cardiac Dysfunction in Childhood Cancer Survivors: How Long Is Screening Required? Pediatr Blood Cancer 62 (12): 2197-203, 2015.26146944
Spewak MB, Williamson RS, Mertens AC, et al.: Yield of screening echocardiograms during pediatric follow-up in survivors treated with anthracyclines and cardiotoxic radiation. Pediatr Blood Cancer 64 (6): , 2017.27966803
Chen Y, Chow EJ, Oeffinger KC, et al.: Traditional Cardiovascular Risk Factors and Individual Prediction of Cardiovascular Events in Childhood Cancer Survivors. J Natl Cancer Inst 112 (3): 256-265, 2020.31161223
Scott JM, Li N, Liu Q, et al.: Association of Exercise With Mortality in Adult Survivors of Childhood Cancer. JAMA Oncol 4 (10): 1352-1358, 2018.29862412
Schindera C, Zürcher SJ, Jung R, et al.: Physical fitness and modifiable cardiovascular disease risk factors in survivors of childhood cancer: A report from the SURfit study. Cancer 127 (10): 1690-1698, 2021.33405260
Rueegg CS, Zürcher SJ, Schindera C, et al.: Effect of a 1-year physical activity intervention on cardiovascular health in long-term childhood cancer survivors-a randomised controlled trial (SURfit). Br J Cancer 129 (8): 1284-1297, 2023.37653075

## Late Effects of the Central Nervous System

### Neurocognitive

Neurocognitive late effects are commonly observed after treatment of malignancies that require central nervous system (CNS)–directed therapies, including the following:

- Cranial radiation therapy.
- Systemic therapy with high-dose methotrexate or cytarabine.
- Intrathecal chemotherapy.
- Neurosurgical procedures.[1,2]

Children with CNS tumors or acute lymphoblastic leukemia (ALL) are most likely to be affected. Risk factors for the development of neurocognitive late effects include the following:[3-7]

- Female sex.
- Younger age at the time of treatment.
- Tumor location.
- Treatment with cranial radiation therapy and/or chemotherapeutic agents (systemic or intrathecal).
- Higher cranial radiation dose.
- Time since treatment.

Cognitive phenotypes observed in childhood survivors of ALL and CNS tumors may differ from traditional developmental disorders. For example, the phenotype of attention problems in ALL and brain tumor survivors appears to differ from developmental attention-deficit/hyperactivity disorder (ADHD) in that few survivors demonstrate significant hyperactivity/impulsivity, but instead have associated difficulties with processing speed and executive function.[8,9]

A Pediatric Normal Tissue Effects in the Clinic (PENTEC) comprehensive review was performed to develop models to facilitate the identification of dose constraints for radiation-associated CNS morbidities.[10]

- Models suggest a 5% risk of a subsequent intelligence quotient (IQ) lower than 85 when the following occurs:
  - 10% of the brain is irradiated to 35.7 Gy.
  - 20% of the brain is irradiated to 29.1 Gy.
  - 50% of the brain is irradiated to 22.2 Gy.
  - 100% of the brain is irradiated to 18.1 Gy.
  - Note: All at 2 Gy/fraction and without methotrexate.
- Methotrexate exposure increased the risk of an IQ score lower than 85, similar to a generalized uniform brain radiation dose of 5.9 Gy. However, a limitation to this analysis was a lack of data about the total methotrexate doses, both intravenous and intrathecal.
- The model for predicting expected IQ, which also included the effect of dose, age, and methotrexate, suggested that each of these factors has an independent but probably cumulative effect on IQ.

In addition to the direct effects of neurotoxic therapies like cranial radiation, Childhood Cancer Survivor Study (CCSS) investigators observed that chronic health conditions resulting from non-neurotoxic treatment exposures (e.g., thoracic radiation) can adversely impact neurocognitive function presumably mediated by chronic cardiopulmonary and endocrine dysfunction.[11] In addition, some sequelae of neurotoxic therapy (e.g., severe hearing loss) have been associated with neurocognitive deficits independent of the neurotoxic treatment received.[12]

A related investigation from the CCSS evaluated longitudinal associations between physical activity and neurocognitive problems in adult survivors of childhood cancer.[13]

- Survivors were less likely than their siblings to report consistent physical activity (28.1% vs. 33.6%).
- Survivors who reported more consistent physical activity had fewer neurocognitive problems and larger improvements in cognitive concerns years after treatment.
- Body mass index (BMI) and severe chronic health conditions partially mediated the physical activity–neurocognitive associations, but the mediation effects were small.

A subsequent systematic review and meta-analysis compared the effects of physical activity or exercise interventions on cognitive function among individuals diagnosed with cancer (aged 0–19 years) with that of controls. Twenty-two unique studies (16 randomized controlled trials) were found with data on 12,767 individuals.[14] The median age at the start of the study was 12 years (interquartile range [IQR], 11–14 years), the median time from the end of cancer treatment was 2.5 years (IQR, 1.1–3.0 years), and the median intervention period was 12 weeks (IQR, 10–24 weeks).

- Compared with controls, there was moderate-quality evidence that physical activity and exercise improved cognitive performance measures and patient-reported measures of cognitive function in cancer survivors.

Childhood cancer survivors may be at risk for cognitive decline throughout their lives (even if not present in the first 10 years after therapy). In a study of 2,375 adult survivors of childhood ALL, Hodgkin lymphoma, or CNS tumors (mean age at evaluation, 31.8 years) and their sibling controls, new onset memory impairment emerged more often in survivors, decades after cancer diagnosis and treatment.[15]

- Compared with siblings, a higher proportion of survivors with no impairment in memory at baseline had new-onset memory impairment at follow-up, as follows:
  - Sibling proportion, 7.8%.
  - ALL survivors treated with chemotherapy only, 14.0%.
  - ALL survivors treated with cranial radiation therapy, 25.8%.
  - CNS tumor survivors, 34.7%.
  - Hodgkin lymphoma survivors, 16.6%.
- Factors associated with new-onset memory impairment included cranial radiation in survivors of CNS tumor (relative risk [RR], 1.97) and dose of 8,000 mg/m^2^ or more of alkylator chemotherapy in survivors of ALL treated without cranial radiation therapy (RR, 2.80).
- Neurological conditions mediated the impact of cranial radiation therapy on new-onset memory impairment in survivors of CNS tumors.
- Smoking, obesity, low education attainment, and low physical activity were associated with an elevated risk of new onset-memory impairment.

#### Neurocognitive outcomes in brain tumor survivors

Long-term cognitive effects caused by illness and associated treatments are well-established morbidities in survivors of childhood and adolescent brain tumors. Risk factors for adverse neurocognitive effects in this group include the following:

- Cranial radiation therapy.
  - Cranial radiation therapy has been associated with the highest risk of long-term cognitive morbidity, particularly in younger children.[3,4]
  - There is an established dose-response relationship, with patients who receive higher-dose cranial radiation therapy consistently performing more poorly on intellectual measures.[3,4,16]
  - Radiation dose to specific regions of the brain, including the temporal lobes and hippocampi, have been shown to significantly impact longitudinal IQ scores and academic achievement scores among children treated with craniospinal irradiation for medulloblastoma.[17]
- Tumor site.[3]
- Shunted hydrocephalus.[18,19]
- Postsurgical cerebellar mutism.[20]
- Auditory difficulties, including sensorineural hearing loss.[12,18]
- History of stroke.[21]
- Seizures.[3,22]
- Socioeconomic status (SES).[23]

The negative impact of radiation treatment has been characterized by changes in IQ scores, which have been noted to drop about 2 to 5 years after diagnosis.[24-26]

- The decline continues 5 to 10 years afterward, although less is known about potential stabilization or further decline of IQ scores several decades after diagnosis.[24,26]
- The decline in IQ scores over time typically reflects the child’s failure to acquire new abilities or information at a rate similar to that of his or her peers, rather than a progressive loss of skills and knowledge.[27]
- Affected children also may experience deficits in other cognitive areas, including academic domains (reading and math) and problems with attention, processing speed, memory, and visual or perceptual motor skills.[28]
- Changes in cognitive functioning may be partially explained by radiation-induced reduction of normal-appearing white matter volume or integrity of white matter pathways, as evaluated through magnetic resonance imaging (MRI).[29,30]
  - Reduced white matter integrity has been directly linked to slowed cognitive processing speed in survivors of brain tumors,[31] while greater white matter volume has been associated with better working memory, particularly in females.[30]
  - Data from contemporary protocols show that using lower doses of cranial radiation, proton beam radiation, and more targeted treatment volumes appears to reduce the severity of neurocognitive effects of therapy.[3,19]

Evidence (predictors of cognitive decline among survivors of CNS tumors):

Longitudinal cohort studies have provided insight into the trajectory and predictors of cognitive decline among survivors of CNS tumors.

1. A multisite, prospective, longitudinal trial evaluated predictors of cognitive performance among 139 infants with brain tumors who were treated with chemotherapy, with or without focal proton or photon radiation therapy.[32]
  - IQ, parent-reported working memory, and parent-reported adaptive functioning were worse than normative expectations at baseline, with younger age and lower SES representing predictive factors.
  - IQ remained stable over time, whereas parent-reported attention and executive dysfunction increased.
  - Cognitive outcomes did not differ by treatment exposure (chemotherapy only vs. chemotherapy with radiation therapy).
  - Changes in cognitive function were associated with supratentorial tumor location and cerebrospinal fluid diversion.
2. St. Jude Children’s Research Hospital (SJCRH) studied 78 children younger than 20 years (mean, 9.7 years) diagnosed with a low-grade glioma.[33]
  - Cognitive decline after 54 Gy of conformal cranial radiation therapy was noted (see Figure 5).
  - Age at time of cranial irradiation was more important than was cranial radiation dose in predicting cognitive decline, with children younger than 5 years estimated to experience the greatest cognitive decline.
    Figure 5. Modeled intelligence quotient (IQ) scores after conformal radiation therapy (CRT) by age for pediatric low-grade glioma. Age is measured in years, and time is measured in months after the start of CRT. Thomas E. Merchant, Heather M. Conklin, Shengjie Wu, Robert H. Lustig, and Xiaoping Xiong, Late Effects of Conformal Radiation Therapy for Pediatric Patients With Low-Grade Glioma: Prospective Evaluation of Cognitive, Endocrine, and Hearing Deficits, Journal of Clinical Oncology, volume 27, issue 22, pages 3691-3697. Reprinted with permission. © (2009) American Society of Clinical Oncology. All rights reserved.
    Graph shows modeled IQ scores after conformal radiation therapy, by age measured in years, and time measured in months, after the start of CRT for pediatric low-grade glioma.
3. In a study of 51 children with low-grade gliomas and low-grade glioneural tumors diagnosed within the first year of life, the following was reported:[34]
  - Mean IQ score was 75.5; 75% of the children had IQ scores lower than 85.
  - Predictors of low IQ included a supratentorial location of the primary tumor and treatment with more chemotherapy regimens but not radiation use.
  - The child’s ability to complete age-appropriate tasks was as affected as IQ scores.
4. A study of 126 medulloblastoma survivors treated with 23.4 Gy or 36 Gy to 39.6 Gy of craniospinal radiation (with a conformal boost dose of 55.8 Gy to the primary tumor bed) assessed processing speed, attention, and memory performance.[35]
  - Processing speed scores declined significantly over time, while less decline was observed in attention and memory performance. Higher doses of radiation and younger age at diagnosis predicted slower processing speed over time.
  - Studies of working memory and academic achievement in patients enrolled on the same medulloblastoma trial (SJCRH SJMB03 [NCT00085202] (https://www.cancer.gov/clinicaltrials/NCT00085202)) indicated that performance was largely within the age-expected range up to 5 years postdiagnosis,[36,37] although in both studies, posterior fossa syndrome, higher cranial radiation dose, and younger age at diagnosis predicted worse performance over time.
  - Serious hearing loss was associated with intellectual and academic decline over time.[37]
5. In a prospective study of 178 children with medulloblastoma, 60 (34%) developed posterior fossa syndrome. Of these patients, 40 (23%) developed complete mutism and 20 (11%) developed diminished speech.[38]
  - All children with posterior fossa syndrome had severe ataxia, and 42.5% of patients with posterior fossa syndrome and complete mutism had movement disorders.
  - Independent risk factors for posterior fossa syndrome included younger age and surgery in a low-volume surgery center. Risk was lower among children with sonic hedgehog (SHH) tumors.
  - Speech and gait returned in children with posterior fossa syndrome and complete mutism at a median of 2.3 and 0.7 months, respectively. Speech and gait returned in children with posterior fossa syndrome and diminished speech at a median of 2.1 and 1.5 months, respectively. However, with 12 months of follow-up, 12 of 27 children (44.4%) with posterior fossa syndrome and complete mutism were nonambulatory at 1 year.
  - The presence of a movement disorder or high ataxia score was associated with delayed speech recovery, whereas older age and high ataxia score were associated with delayed gait return.
  - Symptoms improved in all children, but no child with posterior fossa syndrome had a normal neurological examination at a median of 23 months after surgery.
6. A prospective study compared 36 pediatric patients with medulloblastoma who experienced posterior fossa syndrome with 36 patients with medulloblastoma who did not experience posterior fossa syndrome but were matched on treatment and age at diagnosis.[38,39]
  - The posterior fossa syndrome group demonstrated lower mean scores at 1, 3, and 5 years postdiagnosis on general intellectual ability, processing speed, working memory, and spatial relations compared with the non–posterior fossa syndrome group.
  - The group who experienced posterior fossa syndrome showed little recovery over time and further decline over time in some domains (attention and working memory), compared with the non–posterior fossa syndrome group.
7. Canadian investigators evaluated the impact of radiation (dose and boost volume) and neurological complications on patterns of intellectual functioning in a cohort of 113 medulloblastoma survivors (mean age at diagnosis, 7.5 years; mean time from diagnosis to last assessment, 6 years).[4]
  - Survivors treated with reduced-dose craniospinal radiation therapy plus tumor bed boost showed stable intellectual functioning.
  - Neurological complications, such as hydrocephalus requiring cerebrospinal fluid diversion and mutism, and treatment with higher doses and larger boost volumes of radiation resulted in intellectual declines with distinctive trajectories.
8. Studies are beginning to examine cognitive outcomes in histologically distinct subtypes of brain tumors.
  - Data from a sample of 121 medulloblastoma patients demonstrated variation in cognitive outcomes by four distinct molecular subgroups and differences in patterns of change over time.[40]
  - Future research is required to establish if neurocognitive outcomes vary across biologically distinct subtypes of childhood brain tumors.
9. SES has been shown to predict long-term cognitive outcomes in brain tumor survivors. In a prospective, longitudinal, phase II study of 248 children who were treated with conformal radiation therapy (54–59.4 Gy) for ependymoma, low-grade glioma, or craniopharyngioma, patients were monitored serially with cognitive assessment for 10 years.[23]
  - At preradiation therapy baseline, significant associations were seen between SES and IQ, reading and math scores, sustained attention, and adaptive function. Higher SES was associated with better performance (P < .005).
  - SES predicted change over time in IQ and reading and math scores. Higher SES was associated with less decline (P < .001).
  - These results suggest that higher SES is a protective factor for cognitive late effects.

Evidence (predictors of cognitive decline among long-term survivors of CNS tumors):

Although adverse neurocognitive outcomes observed 5 to 10 years after treatment are presumed to be pervasive, and potentially worsen over time, few empirical data are available regarding the neurocognitive functioning in very long-term survivors of CNS tumors.

1. A longitudinal study evaluated the relationship of hippocampal dose and short-term memory decline in 80 children and adolescents with low-grade gliomas (median age, 9.5 years at treatment) who received 54 Gy of radiation therapy.[41]
  - At a median neurocognitive follow-up of 9.8 years, higher hippocampal dose (volume receiving 40 Gy) was associated with a greater decline in delayed recall.
2. Among adult survivors participating in the CCSS, CNS tumor survivors (n = 802) self-reported significantly more problems with attention/processing speed, memory, emotional control, and organization than did survivors of non-CNS malignancies (n = 5,937) and sibling controls (n = 382).[42]
3. Another CCSS study evaluating patterns of late mortality and morbidity in 2,821 adult survivors of CNS tumors reported impairment on measures of attention/processing speed (42.9%–73.3%) and memory (14.3%–37.4%), with differences observed by diagnosis and cranial radiation dose.[43]
4. A study of 224 adult survivors of pediatric brain tumors participating in the St. Jude Life (SJLIFE) cohort study revealed that 20% to 30% of the survivors demonstrated severe neurocognitive impairment (defined as at least two standard deviations below normative mean) on clinical assessments of intelligence, memory, and executive function (e.g., planning, organization, and flexibility).[3]
  - Among adults in the general population, the expected impairment rate at this threshold is 2%.
  - Survivors who received whole-brain cranial irradiation were 1.5 to 3 times more likely to have severe neurocognitive impairment than were survivors who did not receive any cranial irradiation.
  - Hydrocephalus with shunt placement and seizures were also associated with increased risk of impairment.
5. In the CCSS, investigators compared long-term neuropsychological and SES outcomes of 181 adult survivors of pediatric low-grade gliomas with the outcomes of an age-matched and sex-matched sibling comparison group.[44]
  - Survivors who were treated with surgery and radiation therapy (median age at diagnosis, 7 years; median age at assessment, 41 years) scored lower on estimated IQ than did survivors who were treated with surgery only, who scored lower than siblings (surgery and radiation therapy, 93.9; surgery only, 101.2; siblings, 108.5; all P values < .0001).
  - Younger age at diagnosis was predictive of low scores for all neuropsychological outcomes except for attention/processing speed.
  - Survivors who were treated with surgery and radiation therapy had more-than-twofold–lower occupation scores, income, and education than did survivors who were treated with surgery only.
6. In a retrospective review of 528 brain tumor survivors diagnosed between 2000 and 2015, the prevalence of a clinical diagnosis of ADHD was 13.1%.[45]
  - Of the survivors, 12.1% used medications for ADHD, and 19.9% of survivors had symptoms of ADHD without a clinical diagnosis.
  - ADHD diagnosis was associated with younger age at tumor diagnosis and supratentorial tumor location, but not with sex, tumor type, or treatment type.

The neurocognitive consequences of CNS disease and treatment may have a considerable impact on functional outcomes for brain tumor survivors.

- In childhood and adolescence, neurocognitive deficits have been associated with poor social adjustment, including problems with peer relations, social withdrawal, and reduced social skills.[46,47]
- CNS tumor survivors are more likely to need special education services than are survivors of other malignancies.[48]
- Adult CNS tumor survivors are less likely to live independently, marry, and graduate from college than are survivors of other malignancies and siblings.[49]

##### Cognitive outcomes after proton radiation therapy

Data are emerging regarding cognitive outcomes after proton radiation to the CNS.[50-52] However, these studies have been limited by retrospective analysis of cognitive outcomes among relatively small clinically heterogenous pediatric brain tumor cohorts and the use of historically treated photon patients or population standards as comparison groups.

- In studies largely describing IQ changes during early follow-up (<5 years from radiation), results demonstrate lack of difference in slopes of IQ change among photon-treated and proton-treated patients [50] and significant declines in cognitive processing speed among patients treated with proton radiation.[51]
- One study compared the intellectual trajectories between pediatric patients with medulloblastoma who were treated with proton and photon radiation therapy (4.3-year mean follow-up after median 23.4-Gy craniospinal irradiation dose). Notably, boost dose and margins were significantly different between the two groups.[52]
  - Children treated with proton radiation therapy exhibited superior long-term outcomes in global IQ, perceptual reasoning, and working memory compared with children who were treated with photon radiation therapy.
  - The photon radiation therapy group exhibited a significant decline in global IQ, working memory, and processing speed.
  - The proton radiation therapy group exhibited stable scores over time in all domains, except for processing speed.

Considering the relatively brief follow-up time from radiation, longitudinal follow-up is important to determine whether proton radiation provides a clinically meaningful benefit in sparing cognitive function compared with photon radiation. In addition, more targeted radiation treatment volumes with photons may diminish potential differences.

#### Neurocognitive outcomes in acute lymphoblastic leukemia (ALL) survivors

To minimize the risk of late cognitive sequelae, contemporary therapy for ALL uses a risk-stratified approach that reserves cranial irradiation for children who are considered at high risk of CNS relapse.

##### ALL and cranial radiation

In survivors of ALL, cranial radiation therapy may result in clinical and radiographic neurological late sequelae, including the following:

- Clinical leukoencephalopathy. Clinical leukoencephalopathy characterized by fluctuating encephalopathy, stroke-like symptoms, spasticity, ataxia, dysarthria, dysphagia, hemiparesis, and seizures is uncommon after contemporary ALL therapy. Neuroimaging frequently demonstrates white matter abnormalities among survivors treated with cranial irradiation and/or high-dose methotrexate.
  - Radiographic leukoencephalopathy has been reported in up to 80% of children on some treatment regimens.
  - Higher doses and more courses of intravenous methotrexate have been reported to increase risk of leukoencephalopathy.[53]
  - In many patients, white matter anomalies are transient and decrease in prevalence, extent, and intensity with longer elapsed time from completion of therapy.[53]
  - Leukoencephalopathy results in smaller white matter volumes that have been correlated with cognitive deficits.[53]
  - Although these abnormalities are mild among the irradiated patients (overall IQ decline of approximately 10 points), those who have received higher doses at a young age may have significant learning difficulties.[54,55]
- Neurocognitive deficits. Deficits in neurocognitive functions such as visual-motor integration, processing speed, attention, and short-term memory are reported in children treated with 18 Gy to 24 Gy.[54,56,57]
  - Females and children treated at a younger age are more vulnerable to the adverse impact of cranial radiation on the developing brain.[5]
  - The decline in intellectual functioning appears to be progressive, showing more impairment of cognitive function with increasing time since radiation therapy.[5,6]
  - Limited studies suggest that long-term survivors of childhood ALL treated with cranial irradiation are at risk of progressive decline consistent with early-onset mild cognitive impairment; this risk is most prominent among those treated with cranial radiation doses of 24 Gy.[58,59]

##### ALL and chemotherapy-only CNS therapy

Because of its penetrance into the CNS, systemic methotrexate has been used in a variety of low-dose and high-dose regimens for leukemia CNS prophylaxis.

- Systemic methotrexate in high doses with or without radiation therapy can lead to an infrequent but well-described leukoencephalopathy, which has been linked to neurocognitive impairment.[53]
- When neurocognitive outcomes after radiation therapy and chemotherapy-only regimens are directly compared, the evidence suggests a better outcome for those treated with chemotherapy alone, although some studies show no significant difference.[60,61]
- In a longitudinal analysis of 210 childhood ALL survivors, the development of acute leukoencephalopathy during chemotherapy-only CNS therapy predicted higher risks of developing long-term neurobehavioral problems (e.g., deficits in organization and task initiation [components of executive function]) and reduced white matter integrity in frontal brain regions.[62]
- Compared with cranial irradiation, chemotherapy-only CNS-directed treatment produces neurocognitive deficits involving processes of attention, speed of information processing, memory, verbal comprehension, visual-spatial skills, visual-motor functioning, and executive functioning. Global intellectual function is typically preserved.[56,60,63-65]
- Few longitudinal studies evaluating long-term neurocognitive outcome report adequate data for a decline in global IQ after treatment with chemotherapy alone.[63]
- The academic achievement of ALL survivors in the long term seems to be generally average for reading and spelling, with deficits mainly affecting arithmetic performance.[60,66]
- Risk factors for poor neurocognitive outcome after chemotherapy-only CNS-directed treatment are younger age and female sex.[65,67]
- Reduced cognitive status has been observed in association with reduced integrity in neuroanatomical regions essential in memory formation (e.g., reduced hippocampal volume with increased activation and thinner parietal cortices).[62]
- The long-term impact of these prevalent neurocognitive and neuroimaging abnormalities on functional status in aging adults treated for childhood ALL, particularly those treated with contemporary approaches using chemotherapy alone, remains an active area of research.
- Research in childhood ALL survivors treated with chemotherapy alone suggests that genetic predisposition may modulate risk of developing neurocognitive late effects. It also provides insights into potential mechanisms underlying neurocognitive deficits.[68,69]

Evidence (neurocognitive functioning in large pediatric cancer survivor cohorts):

1. CCSS investigators identified sex-specific associations between treatment and chronic health conditions with neurocognitive impairment among 1,207 survivors of ALL (mean age, 30.6 years) who were treated with chemotherapy only.[7]
  - Both male and female survivors reported increased prevalence of impaired task efficiency (attention and processing speed; adjusted odds ratio [OR], 1.89 for males; OR, 1.50 for females) and impaired memory (OR, 1.89 for males; OR, 1.96 for females) compared with 2,273 same-sex siblings.
  - Among male survivors, impaired task efficiency was associated with grades 2 to 4 neurological conditions (OR, 4.33) and pulmonary conditions (OR, 4.99). Impaired memory was associated with increased cumulative dose of intrathecal methotrexate (OR, 1.68) and exposure to dexamethasone (OR, 2.44).
  - In female survivors, grades 2 to 4 endocrine conditions were associated with higher risk of impaired task efficiency (OR, 2.19) and memory (OR, 2.26).
2. The CCSS examined parent-reported cognitive, behavior, and learning problems from 1,560 adolescent survivors of childhood ALL who were treated with chemotherapy alone between 1970 and 1999.[70]
  - Survivors treated with cranial irradiation had significantly higher frequency of problems in anxiety-depression, inattention-hyperactivity, and social withdrawal than did patients who were not treated with cranial irradiation.
  - Compared with siblings, survivors treated with chemotherapy only were more likely to demonstrate headstrong behavior (19% of survivors vs. 14% of siblings, P = .010), inattention-hyperactivity (19% vs. 14%, P < .0001), social withdrawal (18% vs. 12%, P = .002), and had higher rates of learning problems (28% vs. 14%, P < .0001).
  - In multivariable models among survivors, increased cumulative dose of intravenous methotrexate (i.e., >4.3 g/m^2^) conferred increased risk of inattention-hyperactivity (RR, 1.53).
  - Adolescent survivors with cognitive or behavior problems and those with learning problems were less likely to graduate from college as young adults than adolescent survivors without cognitive or behavior problems.
  - Inattention and hyperactivity problems were associated with the highest risk of special education placement during adolescence. Participation in special education during adolescence did not improve adult educational attainment.
3. The SJCRH TOTAL XVI (NCT00549848) (https://www.cancer.gov/clinicaltrials/NCT00549848) trial evaluated whether a higher dose of pegaspargase and early intensification of triple intrathecal therapy (ITT; methotrexate, hydrocortisone, and cytarabine) would improve systemic and CNS control in children with newly diagnosed ALL. Intensified ITT was defined as more than 21 cumulative doses for patients with low-risk ALL (70 of 194) and more than 27 doses for those with standard- and high-risk ALL (81 of 206). Neurocognitive testing was completed at the end of therapy.[71]
  - The overall group had below age-based norms on measures of global intelligence (P < .0001), attention (P = .0051), working memory (P = .0001), processing speed (P = .0002), fine motor speed (P = .0001), and math skills (P = .0087). Caregiver ratings of patient functioning showed elevated risks of problems in attention (P = .0173), executive function (P = .0001), and adaptive skills (P = .0001).
  - In the low-risk group, there were no significant differences between patients treated with and without intensified ITT.
  - Patients with standard- and high-risk ALL who were treated with intensified ITT had poorer working memory (P = .0328) and fine motor speed (P = .0403), and elevated ratings of inattention (P = .0189) and executive dysfunction (P = .0245). Females in this risk group treated with intensified ITT had lower working memory scores.
4. In the SJCRH Total XV (NCT00137111) (https://www.cancer.gov/clinicaltrials/NCT00137111) trial, which omitted prophylactic cranial irradiation, comprehensive cognitive testing of 243 participants at week 120 revealed the following:[72]
  - A higher risk of below-average performance on a measure of sustained attention but not on measures of intellectual functioning, academic skills, or memory.
  - The risk of cognitive deficits correlated with treatment intensity but not with age at diagnosis or sex.
  - Prolonged follow-up (average, 7.7 years from diagnosis) of this cohort demonstrated that intelligence was within normal limits compared with population expectations, but measures of executive function, processing speed, and memory were less than population means.
  - Higher plasma methotrexate was associated with executive dysfunction, thicker cerebral cortex, and higher activity in frontal brain regions on functional MRI.
5. In a large prospective study of neurocognitive outcomes in children with newly diagnosed ALL, 555 children were randomly assigned to receive CNS-directed therapy according to risk group.[73]
  a. The low-risk group was randomly assigned to receive either intrathecal methotrexate or high-dose methotrexate.
  b. The high-risk group was randomly assigned to receive either high-dose methotrexate or 24 Gy of cranial radiation therapy.
  - A significant reduction in IQ scores (4–7 points) was observed in all patient groups when compared with controls, regardless of the CNS treatment delivered.
  - Children younger than 5 years at diagnosis were more likely to have IQs below 80 at 3 years posttherapy than were children older than 5 years at diagnosis, irrespective of treatment allocation, suggesting that younger children are more vulnerable to treatment-related neurological toxic effects.
6. Persistent cognitive deficits and progressive intellectual decline have been observed in cohorts of adults treated for ALL during childhood and associated with reduced educational attainment and unemployment.[5,55,59] The results of a study of more than 500 adult survivors of childhood ALL (average, 26 years postdiagnosis) showed the following:[55]
  - Survivors demonstrated increased rates of impairment across all neurocognitive domains (ranging from 28.6%–58.9% for each domain).
  - Rate of severe impairment increased as a function of cranial radiation dose and was common among survivors treated with lower doses of cranial irradiation and chemotherapy only.
  - Impairment in executive function skills increased with time since diagnosis in a cranial radiation dose-dependent manner; impairment in intellect, academics, and memory progressively increased with younger age at treatment in a cranial radiation dose-dependent manner; and neurocognitive impairment was related to functional outcomes as adults, including reduced likelihood of college graduation and full-time employment.

##### ALL and steroid therapy

The type of steroid used for ALL systemic treatment may affect cognitive functioning.

- In a study that involved long-term neurocognitive testing (mean follow-up, 9.8 years) of 92 children with a history of standard-risk ALL who had received either dexamethasone or prednisone during treatment, no meaningful differences in mean neurocognitive and academic performance scores were observed.[74]
- In contrast, in a study of 567 adult survivors of childhood leukemia (mean age, 33 years; mean time since diagnosis, 26 years), the following was reported:[55]
  - Dexamethasone exposure was associated with increased risk of impairment in attention (RR, 2.12; 95% confidence interval [CI], 1.11–4.03) and executive function (RR, 2.42; 95% CI, 1.20–4.91), independent of methotrexate exposure.
  - Intrathecal hydrocortisone also increased risk of attention problems (RR, 1.24; 95% CI, 1.05–1.46).

#### Other cancers

Neurocognitive abnormalities have been reported in other groups of cancer survivors. A study of adult survivors of childhood non-CNS cancers (including ALL, n = 5,937) reported the following:[57]

- 13% to 21% of survivors reported impairment in task efficiency, organization, memory, or emotional regulation. This rate of impairment was approximately 50% higher than that reported in the sibling comparison group.
- Factors such as diagnosis before age 6 years, female sex, cranial radiation therapy, and hearing impediment were associated with impairment.

Emerging data suggest that the development of chronic health conditions in adulthood may contribute to cognitive deficits in long-term survivors of non-CNS cancers.

An SJLIFE cohort study evaluated whether children who experienced CNS injury were at higher risk of neurocognitive impairment associated with subsequent late-onset chronic health conditions. A total of 2,859 survivors who were aged 18 years or older and at least 10 years from diagnosis completed a neurocognitive battery and clinical examination. Of these patients, 1,598 had received CNS-directed therapy, including cranial radiation, intrathecal methotrexate, or neurosurgery.[75]

- CNS-treated survivors performed worse than non–CNS-treated survivors on all neurocognitive tests, and they were more likely to have global neurocognitive impairment (46.9% vs. 35.3%).
- A dose-response association was observed between severity/burden score of chronic health conditions and global neurocognitive impairment only among CNS-treated survivors (high OR, 2.24; 95% CI, 1.42–3.53; very high OR, 4.07; 95% CI, 2.30–7.17).
- Cardiovascular and pulmonary conditions were associated with cognitive outcomes (processing speed, executive function, and memory impairment) only in CNS-treated survivors with neurological conditions.

Neurocognitive abnormalities have been reported for the following cancers:

- Acute myeloid leukemia (AML). CCSS investigators compared the neurocognitive and psychosocial outcomes of 482 survivors (median age, 30 years) with those of 3,190 sibling controls (median age, 32 years).[76]
  - Compared with siblings, AML survivors were more likely to report impairment in overall emotional (RR, 2.19; 95% CI, 1.51–3.18), neurocognitive (RR, 2.03; 95% CI, 1.47–2.79), and physical quality of life (RR, 2.71; 95% CI, 1.61–4.56) outcomes.
  - Survivors were also at increased risk of psychosocial deficits, including lower educational attainment (RR, 1.15; 95% CI, 1.03–1.30), unemployment (RR, 1.41; 95% CI, 1.16–1.71), and lower income (RR, 1.39; 95% CI, 1.17–1.65).
  - Outcomes were not statistically different between survivors who were treated with transplant and survivors who were treated with intensive chemotherapy alone.
- Osteosarcoma. In a study evaluating neurocognitive function among 80 long-term survivors of osteosarcoma (mean time since diagnosis, 24.7 years), survivors demonstrated lower mean scores in reading skills, attention, memory, and processing speed than did community controls.[77]
  - The presence of cardiac, pulmonary, and endocrine conditions were significantly associated with worse performance on measures of memory and processing speed.
- Soft tissue sarcoma. A CCSS report characterized the prevalence of and risk factors for self-reported neurocognitive impairment in survivors of rhabdomyosarcoma (n = 713) and their siblings (n = 706). The report also identified risk factors associated with these outcomes in survivors.[78]
  - Compared with their siblings, more survivors reported neurocognitive impairments (task efficiency: 21.1% vs. 13.7%; emotional regulation: 16.7% vs. 11.0%; memory: 19.3% vs. 15.1%). Cranial radiation exposure increased the risk of impaired task efficiency (OR, 2.30).
  - Smoking was associated with impaired task efficiency (OR, 2.06) and memory (OR, 2.23).
  - Neurological and hearing conditions were associated with impaired memory (OR, 2.44 and OR, 1.87, respectively).
  SJLIFE study investigators evaluated neurocognitive function and health status through objective clinical assessments in 150 survivors of childhood soft tissue sarcoma (median age, 33 years; median time from diagnosis, 24 years).[79]
  - Compared with community and population controls, survivors demonstrated lower measures of verbal reasoning, mathematics, and long-term memory.
  - Cumulative anthracycline exposure (per 100 mg/m^2^) was found to be associated with poorer verbal reasoning, reading, and patient-reported vitality.
  - Neurological and neurosensory chronic conditions were associated with poorer mathematics scores and hearing impairment.
  - Better cognitive performance was associated with higher social attainment.
- Wilms tumor. SJLIFE study investigators examined the prevalence and predictors of neurocognitive outcomes, social attainment, emotional distress, and health-related quality of life in long-term survivors of pediatric Wilms tumor (n = 158; median time since diagnosis, 29 years; median age, 33 years) and compared the results to community controls.[80]
  - Long-term Wilms tumor survivors demonstrated lower neurocognitive function, including verbal reasoning, academics, attention, memory, and executive function, than did controls.
  - Wilms tumor survivors were less likely to graduate from college (OR, 2.23) and had more moderate-to-severe neurological conditions than did controls (18.4% vs. 8.2%; P < .001).
- Retinoblastoma. Serial assessment of cognitive and adaptive functioning in a group of retinoblastoma survivors younger than 6 years revealed declines in developmental functioning over time, with the most pronounced declines observed in patients with 13q deletions.[81]
  - Further longitudinal follow-up of this cohort identified improvement in adaptive functioning in all treatment groups and in cognitive function in survivors who were treated with enucleation alone from the age of 5 years to the age of 10 years.[82]
  - At age 10 years, overall functioning was generally within the average range, although estimated IQ was significantly below the normative mean for children who were treated with enucleation alone.[82]
  A study of very long-term adult survivors, who were on average 33 years postdiagnosis, demonstrated largely average cognitive functioning across domains of intelligence, memory, attention, and executive function.[83]
- Lymphoma. Survivors of lymphoma have not historically been considered at risk of developing neurocognitive late effects.
  - However, one report observed that more than two-thirds of survivors of childhood non-Hodgkin lymphoma experienced at least mild neurocognitive impairment, including severe deficits in executive function (13%), attention (9%), and memory (4%).[84]
  - Similarly, in a study of 62 adult survivors of childhood Hodgkin lymphoma, survivors demonstrated worse performance on measures of sustained attention, short- and long-term memory, and cognitive fluency when compared with national normative data.[85] Importantly, measures of cardiac and pulmonary function were also associated with neurocognitive impairment in this group of survivors.
- Neuroblastoma. CCSS investigators compared cognitive outcomes among 837 survivors of neuroblastoma (median age, 1 year at diagnosis; median attained age, 25 years) and a sibling cohort (median attained age, 23 years) using the CCSS Neurocognitive Questionnaire (NCQ).[86]
  - Survivors had a 50% higher risk of impairment with attention/processing speed and emotional regulation.
  - The risk of neurocognitive impairments was higher among survivors with chronic health conditions.
  - Survivors were also less likely to attain adult milestones, such as living independently.

#### Hematopoietic stem cell transplant (HSCT)

Cognitive and academic consequences of HSCT in children have also been evaluated and include, but are not limited to, the following:

- A survey study evaluated late neurocognitive outcomes among 199 survivors of HSCT (HSCT at age <21 years; median follow-up from HSCT, 27.6 years).[87]
  - As assessed by the CCSS NCQ, 18.9% to 32.5% of survivors reported impairments in task efficiency, memory, emotional regulation, or organization, compared with the expected rate of 10% (general population).
  - Quality of life, as assessed by Neuro-Quality of Life Cognitive Function Short Form (Neuro-QoL), among survivors (average T score, 49.6) was comparable to that of the normative population (50).
  - Independent risk factors for impaired Neuro-QoL (T score <40) included hearing issues (OR, 4.7; 95% CI, 1.96–12.6), history of stroke or seizure (OR, 4.46; 95% CI, 1.44–13.8), and sleep disturbances (OR, 6.96; 95% CI, 2.53–19.1).
- SJCRH investigators examined the influence of age and conditioning with total-body irradiation (TBI) on the trajectory of cognitive function after HSCT. Among 315 patients who completed a baseline assessment, 183 were alive at 1 year after HSCT and completed additional assessments at 1, 3, and 5 years.[88]
  - At 5 years after HSCT, younger patients (aged <3 years at baseline) who received TBI demonstrated a significantly lower IQ than those who did not receive TBI.
  - Longitudinal analyses demonstrated a significant impact of age and TBI over time with declines in cognitive functioning during the first year among the youngest patients and recovery of functioning in subsequent years among patients who did not receive TBI.
  - Young patients who received TBI failed to recover the losses experienced during the first year after HSCT, demonstrating stability in their functioning, but at a lower level.

### Neurological Sequelae

Risk of neurological complications may be predisposed by the following:

- Tumor location.
- Neurosurgical procedures.
- Cranial radiation therapy.
- Spinal radiation therapy.
- Specific neurotoxic chemotherapeutic agents.

In children with CNS tumors, mass effect, tumor infiltration, and increased intracranial pressure may result in motor or sensory deficits, cerebellar dysfunction, and secondary effects such as seizures and cerebrovascular complications.[89]

Numerous reports describe abnormalities of CNS integrity and function, but such studies are typically limited by small sample size, cohort selection and participation bias, cross-sectional ascertainment of outcomes, and variable time of assessment from treatment exposures. In contrast, relatively few studies comprehensively or systematically ascertain outcomes related to peripheral nervous system function.

CNS tumor survivors remain at higher risk of new-onset adverse neurological events across their lifetimes than siblings. No plateau has been reached for new adverse sequelae, even 30 years from diagnosis, according to a longitudinal study of 1,876 5-year survivors of CNS tumors from the CCSS. The median time from diagnosis was 23 years, and the median age of the patients studied was 30.3 years.[90]

- Cranial radiation, stroke, tumor recurrence, and development of meningioma were independently associated with late-onset neurological sequelae (seizures, focal neurological dysfunction, and neurosensory abnormalities).
- This finding supports the need to monitor these patients carefully with continued neurological follow-up within or in close association with a multidisciplinary cancer survivor clinic.

Neurological complications that may occur in survivors of childhood cancer include the following:

#### Seizures

The development of seizures may occur secondary to tumor mass effect within the CNS and/or from neurotoxic CNS-directed therapies.

- In 1,876 5-year survivors of CNS tumors from the CCSS, the incidence of seizures increased from 27% in survivors 5 years from diagnosis to 41% in survivors 30 years from diagnosis.[90]
  - Late-onset seizures were associated with frontal lobe radiation of 50 Gy (hazard ratio [HR], 1.8) and temporal lobe radiation in a dose-dependent fashion (HR, 1.9 for 1–49 Gy; HR, 2.2 for >50 Gy).
  - Other risk factors associated with late-onset seizures included recurrence (HR, 2.3), development of meningioma (HR, 2.6), and history of stroke (HR, 2.0).
  - The risk of seizures was elevated for survivors compared with siblings (HR, 12.7).
- Among survivors of childhood leukemia in the CCSS (N = 4,151; 64.5% treated with cranial irradiation), 6.1% reported the development of a seizure disorder, and seizures occurred more than 5 years after diagnosis in 51% of these patients.[91]
- An SJLIFE study evaluated the impact of seizure-related factors on neurocognitive, health-related quality of life (HRQOL), and social outcomes in 2,022 childhood cancer survivors (median age, 31.5 years; median time from diagnosis, 23.6 years).[92]
  - Seizures were identified in 232 survivors (11.5%; 29.9% of survivors with CNS tumors and 9.0% of survivors without CNS tumors).
  - Among CNS tumor survivors, seizures were associated with poorer (based on expected age-adjusted standard z-scores) executive function and processing speed. Seizure resolution was associated with improved attention and memory.
  - Among non-CNS tumor survivors, seizures were associated with worse function in all cognitive domains compared with survivors without seizures. Seizure severity was associated with worse processing speed, and resolution of seizures was associated with better executive function and attention.
  - Non-CNS survivors with seizures had poorer HRQOL outcomes (physical functioning, physical role limitations, and general health). Seizures in both non-CNS and CNS tumor survivors increased the risk of unemployment and part-time employment.

#### Peripheral neuropathy

Vinca alkaloid agents (vincristine and vinblastine) and heavy metals (cisplatin and carboplatin) may cause peripheral neuropathy.[93-95]

- Peripheral neuropathy presents during treatment and appears to improve or clinically resolve after completion of therapy.[93] However, recent studies of long-term survivors suggest that chemotherapy-induced peripheral neuropathy is likely under-ascertained.[96]
- Higher cumulative doses of vincristine and/or intrathecal methotrexate have been linked to neuromuscular impairments in long-term survivors of childhood ALL, which suggests that persistent effects of these agents may affect functional status in aging survivors.[93]
- SJLIFE study investigators observed associations between peripheral neuropathy and impairment in performance measures of movement (mobility and walking endurance) and quality of life (physical functioning, role physical, and general health) among survivors of childhood ALL.[97]
- Static-standing balance impairment (a predictor of falling within the next 90 days) was more common in survivors compared with controls but was not associated with peripheral neuropathy.[97]
- Among adult survivors of extracranial solid tumors of childhood (median time from diagnosis, 25 years), standardized assessment of neuromuscular function disclosed motor impairment in association with vincristine exposure and sensory impairment in association with cisplatin exposure.[94]
  - Survivors with sensory impairment demonstrated a higher prevalence of functional performance limitations related to poor endurance and mobility restrictions.

#### Stroke or other cerebrovascular effects

- Childhood CNS tumor survivors have a 43-fold elevated risk of stroke compared with siblings.[43,98]
  - Cranial radiation therapy (dose dependent), baseline atherosclerosis, hypertension, and African American ethnicity are identified risk factors.[99-101] For information about stroke, see the Cerebrovascular disease section.
- A British CCSS (n = 13,457 survivors) that included 2,885 childhood CNS tumor survivors reported the following:[102]
  - CNS tumor survivors who were treated with cranial irradiation had an increased risk of developing cerebrovascular disease between the ages of 50 years and 65 years.
  - Compared with an expected incidence of 4.2%, the cumulative incidence of cerebrovascular disease in survivors was 11.6% by age 40 years, 16% by age 50 years, and 26% by age 65 years.
- Among 271 CCSS participants with a history of stroke at a median age of 19 years, 70 reported a second stroke at a median age of 32 years.[103]
  - The 10-year cumulative incidence of late recurrent stroke was 21% overall, and 33% for those treated with 50 Gy or higher cranial radiation therapy.
  - Risk factors for recurrent stroke included the following:
    - Cranial radiation therapy 50 Gy or higher (HR, 4.4; 95% CI, 1.4–13.7).
    - Hypertension (HR, 1.9; 95% CI, 1.0–3.5).
    - Older age at first stroke (HR, 6.4; 95% CI, 1.8–23).
- A PENTEC review identified 101 of 3,989 pediatric patients who experienced at least one cerebrovascular toxicity (transient ischemic attack, stroke, moyamoya, or arteriopathy).[104]
  - Predicted incidences were based on the radiation dose to the Circle of Willis: 0.2% at 30 Gy, 1.3% at 45 Gy, and 4.4% at 54 Gy.
  - At an attained age of 35 years, the predicted stroke incidence was 0.9% to 1.3% for 30 Gy, 1.8% to 2.7% for 45 Gy, and 2.8% to 4.1% for 54 Gy (compared with a baseline risk of 0.2%–1.0%).
  - At an attained age of 45 years, the predicted stroke incidence was 1.2% to 4.2% for 30 Gy, 4.5% to 8.6% for 45 Gy, and 6.7% to 13% for 54 Gy (compared with a baseline risk of 0.5%–1.0%).

#### Hypersomnia (daytime sleepiness) or narcolepsy

- In a retrospective review of brain tumor patients treated at SJCRH, investigators identified 39 of 2,336 patients who were diagnosed with hypersomnia/narcolepsy, for a prevalence rate of 1,670 cases per 100,000, which is much higher than a prevalence rate of 20 to 50 cases per 100,000 reported in the general population.[105]
  - This may be an underestimate in childhood brain tumor survivors because many patients with mild-to-moderate symptoms, such as fatigue and sleep disturbances, may not be recognized or referred to a sleep specialist.
  - Hypersomnia/narcolepsy was diagnosed at a median of 6 years (range, 0.4–13.2 years) from tumor diagnosis and 4.7 years (range, 1.5–10.4 years) from cranial radiation.
  - Midline tumor location and antiepilepsy drug use correlated with hypersomnia/narcolepsy, while radiation dose higher than 30 Gy trended toward significance.
  - Posterior fossa tumor location was associated with a reduced risk of hypersomnia.
  - Treatment of hypersomnia/narcolepsy should be individualized and pharmacologic intervention with stimulants may be beneficial.
- In a baseline evaluation of 82 childhood CNS tumor survivors (median age, 13.8 years) participating in a randomized controlled trial of neurofeedback, 48% of survivors endorsed sleep problems and scored significantly worse than the norm on the Sleep Disturbance Scale for Children in the subscales for initiating and maintaining sleep, excessive somnolence, and total scale.[106]
  - Emotional problems and/or hyperactivity/inattention were independent potential risk factors for sleep problems. Sleep problems were also associated with worse parent-reported executive functioning.

#### Other neurological sequelae

- In a report from the CCSS that compared self-reported neurological late effects among 4,151 adult survivors of childhood ALL with siblings, survivors were at elevated risk for late-onset coordination problems, motor problems, seizures, and headaches.[91]
  - The overall cumulative incidence was 44% at 20 years. Serious headaches were most common, with a cumulative incidence of 25.8% at 20 years, followed by focal neurological dysfunction (21.2%) and seizures (7%).
  - Children who were treated with regimens that included cranial irradiation for ALL and those who suffered relapse were at increased risk for late-onset neurological sequelae.
- A cross-sectional study evaluated neurological morbidity and quality of life in 162 survivors of childhood ALL (median age at evaluation, 15.7 years; median time from completion of therapy, 7.4 years) in concert with a clinical neurological examination.[107]
  - Neurological symptoms were present in 83% of survivors, but symptom-related morbidity was low and quality of life was high in most survivors.
  - The most commonly reported symptoms included neuropathy (63%), headache (46.9%), dizziness (33.3%), and back pain (22.8%).
  - Female sex, ten doses or more of intrathecal chemotherapy, cranial irradiation, CNS leukemia at diagnosis, and history of ALL relapse were associated with neurological morbidity.
- Neuroimaging studies of irradiated and nonirradiated ALL survivors demonstrate a variety of CNS abnormalities, including leukoencephalopathy, cerebral lacunes, cerebral atrophy, and dystrophic calcifications (mineralizing microangiopathy).[53,59,108,109]
  - Among these, abnormalities of cerebral white matter integrity and volume have been correlated with neurocognitive outcomes.
- Cavernomas have also been observed in ALL survivors treated with cranial irradiation. They have been speculated to result from angiogenic processes as opposed to tumorigenesis.[110]
- In a retrospective cross-sectional study, 101 survivors of childhood ALL (mean time since diagnosis, 27.6 years) who were treated with cranial irradiation (63.4% received ≤18 Gy) underwent neurocognitive testing and 3T brain MRI.[111]
  - Small focal intracerebral hemorrhages that are only visible on exquisitely sensitive MRI sequences were identified and localized using susceptibility weighted imaging.
  - At least one microbleed was present in 85% of survivors, and they occurred more frequently in frontal lobes.
  - A radiation dose of 24 Gy conveyed a fivefold greater risk of having multiple microbleeds when compared with a dose of 18 Gy.
  - No significant difference was found in neurocognitive scores with either the absence or presence of microbleeds or their location.
- CCSS investigators evaluated treatment-related neurological sequelae in survivors of childhood CNS tumors.[90]
  - In 1,876 5-year survivors of CNS tumors from the CCSS, the cumulative incidence of headaches increased from 38% at 5 years to 53% at 30 years since diagnosis.
  - Coordination problems increased from 21% at 5 years to 53% at 30 years since diagnosis, and motor impairment increased from 21% to 35% during this same time period.
  - Increased risk of motor impairment was associated with tumor recurrence (HR, 2.6), development of a meningioma (HR, 2.3), and stroke (HR, 14.9).
  - The cumulative incidence of hearing loss increased from 9% at 5 years to 23% at 30 years, cumulative incidence of tinnitus increased from 8% at 5 years to 21% at 30 years, and cumulative incidence of vertigo increased from 9% at 5 years to 17% at 30 years.
  - Risks of motor impairment (HR, 7.6) and hearing loss (HR, 18.4) were elevated compared with siblings.
- CCSS investigators estimated the prevalence and cumulative incidence of neuromuscular dysfunction (motor or sensory dysfunction) among 25,583 childhood cancer survivors and 5,044 siblings.[112]
  - Neuromuscular dysfunction was prevalent in 14.7% of survivors 5 years after diagnosis, compared with 1.5% in siblings (prevalence ratio [PR], 9.9%; 95% CI, 7.9–12.4).
  - The prevalence of neuromuscular dysfunction was highest in survivors of CNS tumors (PR, 27.6; 95% CI, 22.1–34.6) and sarcomas (PR, 11.5; 95% CI, 9.1–14.5).
  - The 20-year cumulative incidence increased to 24.3% in survivors 20 years after diagnosis.
  - Cancer treatments associated with increased prevalence of neuromuscular dysfunction included spinal radiation therapy, increasing doses of cranial radiation therapy, and platinum agents.
  - Neuromuscular dysfunction was associated with downstream adverse outcomes, including concurrent or later obesity (PR, 1.1; 95% CI, 1.1–1.2), anxiety (PR, 2.5; 95% CI, 2.2–2.9), depression (PR, 2.1; 95% CI, 1.9–2.3), and lower likelihood of graduating college (PR, 0.92; 95% CI, 0.90–0.94) and finding employment (PR, 0.8; 95% CI, 0.8–0.9).
- SJLIFE investigators assessed motor and sensory impairment in 378 survivors of childhood CNS tumors (5 years or longer from diagnosis) and 445 age-, sex-, and race-matched controls, using the modified Total Neuropathy Score.[113]
  - Among survivors, 91 (24.1%; 95% CI, 19.8%–29.4%) had any grade 2 or higher motor or sensory impairment (motor only, 27 [7.1%]; sensory only, 40 [10.6%]; both, 24 [6.4%]).
  - Survivors were more likely than controls to have grade 2 or higher impairment (13.5% for survivors [7.7% for grade 2 and 5.8% for grade 3] vs. 0.9% for controls; P < .001).
  - Survivors of ependymoma had the highest prevalence of motor impairment (22.0%), and survivors of medulloblastoma had the highest prevalence of sensory impairment (33.3%).
  - Treatment factors associated with grade 2 or higher motor impairment in multivariable models included vinca alkaloid exposure of 15 mg/m^2^ or less compared with no exposure (OR, 4.38; 95% CI, 1.06–18.08) and etoposide exposure of more than 2,036 mg/m^2^ compared with no exposure (OR, 12.61; 95% CI, 2.19–72.72).
- Radiation myelopathy is a rare but severe complication of radiation therapy exposure. The PENTEC spinal cord task force examined the factors that potentially contribute to radiation myelitis in the pediatric population.[114]
  - Thirty-two patients (treated between 1962 and 2002) with radiation myelopathy were identified, for a crude incidence of 0.5%. The median age was 13 years, and 52% of the patients were male. No apparent association was identified for age at the time of radiation therapy. The most common cancer diagnoses were rhabdomyosarcoma, medulloblastoma, and Hodgkin lymphoma.
  - The median radiation dose was 40 Gy, and the fraction size was 1.8 Gy. The median latency period from completion of radiation therapy to development of radiation myelopathy was 7 months (range, 1–29 months), with higher radiation therapy doses correlating with longer latency periods (P = .03).
  - The most common chemotherapies given to patients with radiation myelopathy were vincristine, intrathecal (IT) methotrexate, and IT cytarabine. Ten patients received vincristine, IT methotrexate, and IT cytarabine.
  - Chemotherapy appears to reduce spinal cord tolerance to radiation. The radiation therapy dose resulting in radiation myelopathy was lower in patients who received chemotherapy than in those who did not receive chemotherapy (39.6 ± 8.7 Gy vs. 49.7 ± 8.2 Gy; P = .04).
  - Eight of the 32 cases of radiation myelopathy occurred in patients treated on a single Intergroup Rhabdomyosarcoma Study Group (treated with intensive IT methotrexate and cytarabine chemotherapy).
  - Many of the reports were from an era before CT-based treatment planning. Also, the investigators could not find any signs that the developing spinal cord is more sensitive than the adult spinal cord.

Table 4 summarizes CNS late effects and the related health screenings.

Table 4. Central Nervous System Late Effects^a^

Predisposing Therapy | Neurological Effects | Health Screening
Heavy metals (carboplatin, cisplatin) | Peripheral sensory neuropathy | Neurological examination
Vinca alkaloid agents (vinblastine, vincristine) | Peripheral sensory or motor neuropathy (areflexia, weakness, foot drop, paresthesias) | Neurological examination
Methotrexate (high dose IV or IT); cytarabine (high dose IV or IT); radiation exposing the brain | Clinical leukoencephalopathy (spasticity, ataxia, dysarthria, dysphagia, hemiparesis, seizures); headaches; seizures; sensory deficits | History: cognitive, motor, and/or sensory deficits, seizures
Methotrexate (high dose IV or IT); cytarabine (high dose IV or IT); radiation exposing the brain | Clinical leukoencephalopathy (spasticity, ataxia, dysarthria, dysphagia, hemiparesis, seizures); headaches; seizures; sensory deficits | Neurological examination
Radiation exposing cerebrovascular structures | Cerebrovascular complications (stroke, Moyamoya disease, occlusive cerebral vasculopathy) | History: transient/permanent neurological events
Radiation exposing cerebrovascular structures | Cerebrovascular complications (stroke, Moyamoya disease, occlusive cerebral vasculopathy) | Blood pressure test
Radiation exposing cerebrovascular structures | Cerebrovascular complications (stroke, Moyamoya disease, occlusive cerebral vasculopathy) | Neurological examination
Neurosurgery–brain | Motor and/or sensory deficits (paralysis, movement disorders, ataxia, eye problems [ocular nerve palsy, gaze paresis, nystagmus, papilledema, optic atrophy]); seizures | Neurological examination
Neurosurgery–brain | Motor and/or sensory deficits (paralysis, movement disorders, ataxia, eye problems [ocular nerve palsy, gaze paresis, nystagmus, papilledema, optic atrophy]); seizures | Neurology evaluation
Neurosurgery–brain | Hydrocephalus; shunt malfunction | Abdominal x-ray
Neurosurgery–brain | Hydrocephalus; shunt malfunction | Neurosurgery evaluation
Neurosurgery–spine | Neurogenic bladder; urinary incontinence | History: hematuria, urinary urgency/frequency, urinary incontinence/retention, dysuria, nocturia, abnormal urinary stream
Neurosurgery–spine | Neurogenic bowel; fecal incontinence | History: chronic constipation, fecal soiling
Neurosurgery–spine | Neurogenic bowel; fecal incontinence | Rectal examination
Predisposing Therapy | Neurocognitive Effects | Health Screening
Methotrexate (high-dose IV or IT); cytarabine (high-dose IV or IT); radiation exposing the brain; neurosurgery–brain | Neurocognitive deficits (executive function, memory, attention, processing speed, etc.); learning deficits; diminished IQ; behavioral change | Assessment of educational and vocational progress
Methotrexate (high-dose IV or IT); cytarabine (high-dose IV or IT); radiation exposing the brain; neurosurgery–brain | Neurocognitive deficits (executive function, memory, attention, processing speed, etc.); learning deficits; diminished IQ; behavioral change | Formal neuropsychological evaluation

IQ = intelligence quotient; IT = intrathecal; IV = intravenous.

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### Psychosocial

Many childhood cancer survivors report reduced quality of life, impaired health status, or other adverse psychosocial outcomes, compared with siblings or noncancer population groups.[115,116] Vulnerable groups have been identified related to sociodemographic factors (e.g., female sex), specific cancer diagnoses (e.g., CNS tumor), cancer treatments (e.g., cranial radiation therapy), health behaviors (e.g., smoking), and type/cumulative burden of chronic health conditions. The diagnosis of childhood cancer may also affect psychosocial outcomes and the expected attainment of functional and social independence in adulthood. Several investigations have demonstrated that survivors of pediatric CNS tumors are particularly vulnerable.[49,117]

Evidence for adverse psychosocial adjustment after childhood cancer has been derived from sources, ranging from patient-reported or proxy-reported outcomes to data from population-based registries. The former may be limited by small sample size, cohort selection and participation bias, and variable methods and venues (clinical vs. distance-based survey) of assessments. The latter is often not well correlated with clinical and treatment characteristics that permit the identification of survivors at high risk of psychosocial deficits.

#### Achievement of social milestones

Survivors with neurocognitive deficits are particularly vulnerable to deficits in achievement of expected social outcomes during adulthood.

- Adult survivors of childhood cancer participating in the CCSS who were treated with CNS-directed therapies did not achieve independence at rates comparable with survivors who did not receive CNS-directed therapies or their sibling counterparts. Associations between neurological late effects and attainment of independence were examined in adult survivors of cancer treated with (n = 7,881) and without CNS-directed therapies (n = 8,039) and a sibling cohort (n = 3,994). Compared with the other groups, survivors of childhood cancer treated with CNS-directed therapies showed three distinct patterns of functional independence: (1) moderately independent, never married, and nonindependent living (78.7%); (2) moderately independent, unable to drive (15.6%); (3) not independent (5.7%). No survivors treated with CNS-directed therapies were fully independent (a fourth identified class). In contrast, 50% of survivors who did not receive CNS treatment and 60% of siblings were classified as fully independent. Nonindependence was associated with emotional distress symptoms (i.e., depression, anxiety, somatization, and suicidal ideation).[118]
- In a population-based study of adult survivors of CNS tumors diagnosed in childhood or adolescence, survivors had significantly poorer self-perception and self-esteem than did individuals in the general population. Female sex, persistent visible physical sequelae, specific tumor type, and treatment with cranial radiation therapy predicted poor self-perception outcomes.[119]
- In a series of CNS malignancy survivors (n = 802) reported from the CCSS, adverse outcome on multiple indicators of successful adult adjustment (educational achievement, income, employment, and marital status) were most prevalent among survivors who reported neurocognitive dysfunction.[42]
- Collectively, studies evaluating psychosocial outcomes among CNS tumor survivors indicate deficits in social competence that worsen over time.[120] This includes problems with peer rejection and isolation in childhood/adolescence, and the inability to develop friendships and romantic relationships as adults.
- In an SJLIFE study of 224 survivors of CNS tumors (median current age, 26 years; median time from diagnosis, 18 years), neurocognitive impairment was significantly associated with lower educational attainment, unemployment, and dependent living.[3]
  - Among one subgroup, significant impairments in social perceptions skills, including affect recognition, contributed to limited achievement of functional outcomes. Self-reports of social adjustment were generally within normal limits, suggesting limited self-insight into social deficits.[121]
- In a series of 1,560 adolescent survivors of childhood ALL treated with chemotherapy alone, the CCSS identified a significant proportion of survivors who still experienced problems with headstrong behavior, inattention-hyperactivity, and social withdrawal, which were associated with an increased risk of special education placement and predicted reduced adult educational attainment.[70]
- In a cross-sectional study of 855 childhood leukemia survivors (mean, 10.2 years from diagnosis) in the Leucémie de l’Enfant et de l’Adolescent (LEA) cohort, investigators identified independent factors associated with repeating a grade in school, including low parental education and household financial difficulties, emphasizing the importance of considering socioeconomic factors that may affect access to educational support. Survivors who were adolescents (aged 11–17 years) at diagnosis were also at greater risk than were survivors who were children (aged <11 years) at diagnosis.[122]
- In a population-based, cross-sectional, survivorship study, 28% of adolescent and young adult (AYA) survivors of sarcoma (aged 18–39 years at diagnosis; median time from diagnosis, 6.2 years) experienced impaired social functioning.[123] Multivariable analysis identified independent associations with impaired social functioning and unemployment (OR, 3.72; 95% CI, 1.26–10.97) and having to make lifestyle changes because of financial problems caused by an individual's physical condition or medical treatment (OR, 3.39; 95% CI, 1.12–10.30). In contrast, better social support reduced the risk of impaired social functioning (OR, 0.74; 95% CI, 0.57–0.96).

#### Psychological distress and suicidality

Childhood cancer survivors are also at risk of developing symptoms of psychological distress and suicidality.[124]

- A CCSS report characterized the prevalence of and risk factors for self-reported emotional distress and HRQOL in survivors of rhabdomyosarcoma (n = 713) and their siblings (n = 706). The study also identified risk factors associated with these outcomes in survivors.[78]
  - Compared with their siblings, more survivors reported elevated emotional distress (somatic distress: 12.9% vs. 4.7%; anxiety: 11.7% vs. 5.9%; depression: 22.8% vs. 16.9%) and poorer HRQOL (physical functioning: 11.1% vs. 2.8%; role functioning due to physical problems: 16.8% vs. 8.2%; pain: 17.5% vs. 10.0%; vitality: 22.3% vs. 13.8%; social functioning: 14.4% vs. 6.8%; emotional functioning: 17.1% vs. 10.6%).
  - Chest and pelvic radiation exposure predicted an increased risk of impaired physical functioning (OR, 2.68 and 3.44, respectively).
  - Smoking was associated with anxiety (OR, 2.71) and depression (OR, 1.77).
  - Neurological conditions increased the risk of anxiety (OR, 2.30), and hearing conditions increased the risk of depression (OR, 1.79).
- The SJLIFE study was used to compare the risks of suicidal ideation, suicidal behaviors, and mortality in adult survivors of childhood cancer with those of the general population.[125]
  - Survivors (n = 3,096) reported a similar 12-month prevalence of suicidal ideation compared with the general population (standardized incidence ratio [SIR], 0.68) and a lower prevalence of suicidal behaviors (planning: SIR, 0.17; attempts: SIR, 0.07) and mortality (standardized mortality ratio, 0.60).
  - Among survivors, depression (RR, 12.30), anxiety (RR, 2.19), and financial stress (RR, 1.47) were found to be risk factors associated with suicidal ideation.
  - Survivors who were currently single, widowed, or divorced; who were not working full time; who reported financial stress during the previous year; and who reported sleep disturbances had an approximately 30% to 50% higher prevalence of suicidal ideation.
- A CCSS study evaluated the prevalence of recurrent suicidal ideation among 9,128 adult long-term survivors of childhood cancer.[126]
  - Survivors were more likely to report late suicidal ideation (OR, 1.9; 95% CI, 1.5–2.5) and recurrent suicidal ideation (OR, 2.6; 95% CI, 1.8–3.8) compared with siblings.
  - History of seizure was associated with a twofold increased likelihood of suicide ideation in survivors.
- A population-based study evaluated suicide among adults treated for cancer before age 25 years.[127]
  - The absolute risk of suicide was low (24 cases among 3,375 deaths).
  - The HR of suicide was increased among individuals treated for cancer in childhood (0–14 years; HR, 2.5; 95% CI, 1.7–3.8) and in adolescence and young adulthood (15–24 years; HR, 2.3; 95% CI, 1.2–4.6).

The presence of chronic health conditions can also impact aspects of psychological health.

- In a study that evaluated psychological outcomes among long-term survivors treated with HSCT, 22% of survivors and 8% of sibling controls reported adverse outcomes. Somatic distress was the most prevalent condition and affected 15% of HSCT survivors, representing a threefold higher risk compared with siblings. HSCT survivors with severe or life-threatening health conditions and active chronic GVHD had a twofold increased risk of somatic distress.[128]
- A report from the CCSS revealed that the presence of chronic pulmonary, endocrine, and cardiac conditions was associated with increased risk of psychological distress symptoms in a sample of 5,021 adult survivors of childhood cancer.[129]
- In a CCSS investigation that evaluated long-term psychological and educational outcomes among survivors of neuroblastoma, survivors demonstrated elevated risks of psychological impairment, which was associated with the use of special education services and lower educational attainment. The presence of two or more chronic health conditions, but not common treatment exposures, predicted psychological impairment. Specifically, pulmonary disease predicted impairment in all five psychological domains, whereas endocrine disease and peripheral neuropathy each predicted impairment in three domains.[130]

Incorporation of psychological screening into clinical visits for childhood cancer survivors may be valuable. However, limiting such evaluations to those returning to long-term follow-up clinics may result in a biased subsample of survivors with more difficulties, and precise prevalence rates may be difficult to establish.

- In a study of 101 adult survivors of childhood cancer, psychological screening was performed during a routine annual evaluation at the survivorship clinic at the Dana Farber Cancer Institute.[131]
  - On the Symptom Checklist 90 Revised, 32 survivors had a positive screen (indicating psychological distress), and 14 survivors reported at least one suicidal symptom.
  - Risk factors for psychological distress included survivors' dissatisfaction with physical appearance, poor physical health, and treatment with cranial irradiation.
  - This instrument was shown to be feasible for use in the clinic-visit setting because the psychological screening was completed in less than 30 minutes and did not appear to cause distress in the survivors in 80% of cases.

For more information about psychological distress, depression, and cancer patients, see Adjustment to Cancer: Anxiety and Distress and Depression.

#### Serious mental illnesses

A population-based study from Taiwan compared the prevalence of serious mental illnesses in 5,121 childhood and adolescent cancer survivors with that of population controls.[132]

- Survivors (mean age, 9 years; 60% were 5 or more years from diagnosis) showed increased risks of six serious mental illnesses compared with controls. These disorders included the following:
  - Autism spectrum disorder (HR, 10.42; 95% CI, 4.58–23.69).
  - ADHD (HR, 6.59; 95% CI, 4.91–8.86).
  - Bipolar disorder (HR, 2.93; 95% CI, 1.26–6.80).
  - Major depressive disorder (HR, 1.88; 95% CI, 1.26–2.79).
  - Obsessive-compulsive disorder (OCD) (HR, 3.37; 95% CI, 1.33–8.52).
  - Post-traumatic stress disorder (PTSD) (HR, 6.10; 95% CI, 1.46–25.54).
- Survivors were younger than controls at the time of diagnosis of ADHD, schizophrenia, major depressive disorder, and OCD.
- Risks of serious mental illnesses varied according to specific cancer types. The greatest number of major psychiatric disorders was observed among survivors of brain cancer and lymphatic/hematopoietic tissue cancer.

A population-based study linked individuals with a history of six common cancers diagnosed at age 15 to 21 years to provincial health care data to compare rates of outpatient (family physician and psychiatrist) visits for psychiatric indications and time to severe psychiatric events (emergency room visit, hospitalization, and suicide). The study included 2,208 AYA cancer patients and 10,457 matched controls.[133]

- Five-year AYA survivors experienced higher rates of outpatient mental health visits than did controls (671 vs. 506 visits per 1,000 person-years; RR, 1.3), higher risk of a severe psychiatric episode (HR, 1.2), and higher risk of a psychotic disorder–associated severe event (HR, 2.0).
- Treatment in an adult center was associated with substantially higher outpatient visit rates compared with treatment in pediatric settings (RR, 1.8).

#### PTSD after childhood cancer

Despite the many stresses associated with the diagnosis of cancer and its treatment, studies have generally shown low levels of post-traumatic stress symptoms and PTSD in children with cancer, typically no higher than those in healthy comparison children.[134]

- The prevalence of PTSD and post-traumatic stress symptoms has been reported in 15% to 20% of young adult survivors of childhood cancer, with estimates varying based on criteria used to define these conditions.[135]
- In a cohort of 5,121 childhood and adolescent cancer survivors (mean age, 9 years), the incidence of PTSD was 0.59%. Compared with controls, survivors showed a 6.10-fold elevated risk of being diagnosed with PTSD. Brain cancer survivors had the highest risk of all cancer diagnoses for PTSD (HR, 18.50; 95% CI, 2.11–162.64).[132]
- Patient and parent adaptive style appear to be significant determinants of PTSD in the pediatric oncology setting.[136,137]
- Survivors with PTSD reported more psychological problems and negative beliefs about their illness and health status than did those without PTSD.[138,139]
- A subset of adult survivors (9%) from the CCSS reported functional impairment and/or clinical distress in addition to the set of symptoms consistent with a full diagnosis of PTSD.[140]
  - PTSD was significantly more prevalent in survivors than in sibling comparisons.
  - PTSD was significantly associated with being unmarried, having an annual income of less than $20,000, being unemployed, having a high school education or less, and being older than 30 years.
  - Survivors who were treated with cranial irradiation before age 4 years were at particularly higher risk of developing PTSD.
  - Intensive cancer-directed therapy was also associated with increased risk of full PTSD.
- Because avoidance of places and persons associated with the cancer is part of PTSD, the syndrome may interfere with obtaining appropriate health care.[141]
  - Those with PTSD perceive greater current threats to their lives or the lives of their children.
  - Other risk factors for PTSD include poor family functioning, decreased social support, and noncancer stressors.

#### Psychosocial outcomes among childhood, adolescent, and young adult cancer survivors

Most research on late effects after cancer has focused on individuals with a cancer diagnosis during childhood. Little is known about the specific impact of a cancer diagnosis with an onset in adolescence or the impact of childhood cancer on AYA psychosocial outcomes.

Evidence (psychosocial outcomes in AYA cancer survivors):

1. Adult survivors of cancer diagnosed during adolescence (aged 15–18 years) (N = 825) were compared with an age-matched sample from the general population and a comparison group of adults without cancer.[142]
  - Female survivors of adolescent cancers achieved fewer developmental milestones related to their psychosexual development, such as having their first boyfriend, or they reached these milestones later.
  - Male survivors were more likely to live with their parents than were same-sex controls.
  - Adolescent cancer survivors were less likely to have ever married or have had children. Survivors were significantly older at their first marriage and at the birth of their first child than were their age-matched samples.
  - Survivors in this cohort were also significantly less satisfied with their general and health-related life than were people in a community-based control group. Impaired general and health-related life satisfaction were associated with somatic late effects, symptoms of depression and anxiety, and lower rates of posttraumatic growth.[143]
2. A survey of 4,054 AYA cancer survivors and 345,592 respondents who had no history of cancer reported the following:[144]
  - AYA cancer survivors were more likely to smoke (26% vs. 18%), be affected by obesity (31% vs. 27%), and have chronic conditions such as cardiovascular disease (14% vs. 7%), hypertension (35% vs. 9%), asthma (15% vs. 8%), disability (36% vs. 18%), and poor mental health (20% vs. 10%).
  - They were also less likely to receive medical care because of cost (24% vs. 15%).
3. The CCSS evaluated outcomes of 2,979 adolescent survivors and 649 siblings of childhood cancer survivors to determine the incidence of difficulty in six behavioral and social domains (depression/anxiety, being headstrong, attention deficit, peer conflict/social withdrawal, antisocial behaviors, and social competence).[145]
  - Survivors were 1.5 times (95% CI, 1.1–2.1) more likely than siblings to have symptoms of depression/anxiety and 1.7 times (95% CI, 1.3–2.2) more likely than siblings to have antisocial behaviors.
  - Scores in the depression/anxiety, attention deficit, and antisocial domains were significantly elevated in adolescents treated for leukemia or CNS tumors, compared with the scores in siblings.
  - In addition, survivors of neuroblastoma had difficulty in the depression/anxiety and antisocial domains.
  - CNS-directed treatments (cranial radiation therapy and/or intrathecal methotrexate) were specific risk factors for adverse behavioral outcomes.
4. Another CCSS study evaluated psychological and neurocognitive function in 2,589 long-term cancer survivors who were diagnosed during adolescence and young adulthood.[146]
  - Compared with a sibling cohort, survivors diagnosed during adolescence and young adulthood reported higher rates of depression (OR, 1.55; 95% CI, 1.04–2.30) and anxiety (OR, 2.00; 95% CI, 1.17–3.43) and reported more cognitive problems affecting task efficiency (OR, 1.72; 95% CI, 1.21–2.43), emotional regulation (OR, 1.74; 95% CI, 1.26–2.40), and memory (OR, 1.44; 95% CI, 1.09–1.89).
  - Survivors of lymphoma and sarcoma diagnosed during later adolescence were at reduced risk of psychosocial and neurocognitive problems than were those diagnosed before age 11 years. These outcomes did not differ by age at diagnosis among CNS tumor and leukemia survivors.
  - Survivors diagnosed during adolescence and young adulthood were also significantly less likely than sibling controls to have attained a post–high school education, be working full time, be married, or be living independently; inferior social outcomes were related to neurocognitive symptoms.
5. A follow-up CCSS study evaluated profiles of symptom comorbidities in 3,993 adolescents (aged 13–17 years) treated for cancer.[147] Latent profile analysis identified four symptom profiles:
  - No significant symptoms.
  - Elevated internalizing symptoms (anxiety and/or depression, social withdrawal, and attention problems).
  - Elevated externalizing symptoms (headstrong behavior and attention problems).
  - Elevated internalizing and externalizing symptoms.
  Overall results support that behavioral, emotional, and social symptoms frequently co-occur and are associated with treatment exposures (cranial radiation, corticosteroids, and methotrexate) and late effects (obesity, cancer-related pain, and sensory impairments) in adolescent survivors diagnosed between 1970 and 1986.
6. Another CCSS study characterized the prevalence and risk of pain, clinically significant interference in daily activities because of pain, and recurrent pain in 10,012 adult survivors of childhood cancer (median time since diagnosis, 23 years).[148]
  - A significant minority of survivors endorsed moderate to severe pain (29%), moderate to extreme pain interference (20%), and moderate to severe recurrent pain (9%).
  - Older age at diagnosis and follow-up, female sex, and presence of grades 3 to 4 chronic medical conditions were consistently associated with an increased risk of worse pain outcomes.
  - Minority racial and ethnic groups, diagnosis of CNS tumor, and treatment with platinum-based chemotherapy and cranial radiation were associated with an increased risk of late-occurrence pain and pain interference.
  - Depression and anxiety were associated with increased risk of all pain outcomes, and poor vitality mediated the effects of anxiety on high pain and pain interference.
7. An SJLIFE study evaluated the associations between comprehensive medical, neurocognitive, and physical performance assessments and self-reported pain, quality of life, and social functioning in 2,836 survivors (mean age, 32.2 years; mean time since diagnosis, 23.7 years) and 343 noncancer community controls.[149]
  - Moderate-to-very-severe pain with moderate-to-extreme daily interference was endorsed by 18% of survivors, compared with 8% of controls (P < .001).
  - Survivors of soft tissue sarcoma (OR, 9.25), non-Hodgkin lymphoma (OR, 4.13), and Ewing sarcoma and/or osteosarcoma (OR, 3.93) had the highest odds of pain with daily interference, compared with controls.
  - In multivariable models that included treatment exposures, histories of amputation (OR, 1.89) and/or limb-sparing surgery (OR, 2.30) were associated with increased odds of pain with daily interference.
  - Pain with daily interference was associated with an increased risk of impaired neurocognition (attention: RR, 1.88; memory: RR, 1.65) and physical functioning (aerobic capacity: RR, 2.29; mobility: RR, 1.71).
  - Pain with daily interference was also associated with an increased risk of impaired social functioning (inability to hold a job and/or attend school: RR, 4.46; assistance with routine and/or personal care needs: RR, 5.64), and health-related quality of life (physical: RR, 6.34; emotional: RR, 2.83).
8. A Nordic, register-based cohort study evaluated whether childhood cancer survivors (n = 18,621) were at a higher risk of developing psychiatric disorders later in life than their siblings (n = 24,775) and the general population (n = 88,630).[150]
  - The cumulative incidence of contact with a psychiatric hospital by age 30 years was 15.9% for childhood cancer survivors, 14.0% for siblings, and 12.7% for matched (by birth year, sex, and country/municipality) population controls.
  - The absolute difference was small, but survivors were still at a higher RR for any psychiatric hospital contact than their siblings (1.39) and matched controls (HR, 1.34).
9. A CCSS study evaluated associations between treatment changes and neurocognition as well as the impact of neurocognition and chronic health conditions on adult independence in 1,284 adult survivors of childhood gliomas (median age, 30 years at assessment and 22 years from diagnosis).[151]
  - Cranial radiation exposure decreased over the study period (1970s–1990s).
  - Survivors with any treatment exposures (surgery only, chemotherapy with or without surgery, cranial radiation therapy with or without chemotherapy/surgery) had an elevated risk of neurocognitive impairment, compared with siblings.
  - While most long-term glioma survivors in the cohort achieved adult independence, associations with treatment-related neurocognitive impairment and chronic health conditions were observed among those with functional nonindependence.

Evidence (functional and social independence):

1. In a study of 665 survivors of CNS tumors (54% male; 52% treated with cranial radiation therapy; median age, 15 years; and 12 years from diagnosis), CCSS investigators observed the following:[117]
  - Almost 50% of survivors experienced social difficulties related to peer relationships that exceeded those of survivors of solid tumors and sibling controls.
  - Cranial radiation exposure predicted impaired social and peer relationships, and cognitive impairment mediated these associations.
2. An SJLIFE study investigated functional and social independence in 306 CNS tumor survivors (astrocytoma [n = 130], medulloblastoma [n = 77], ependymoma [n = 36], and other [n = 63]; median age, 25 years; and time since diagnosis, 16.8 years).[49]
  - Only 40% of long-term survivors in the study cohort achieved complete independence as adults.
  - Predictors of nonindependence included treatment with craniospinal irradiation, history of hydrocephalus with shunting, and younger age at diagnosis.
  - Beyond impaired IQ scores, functional limitations in aerobic capacity, flexibility, and adaptive physical function were significantly associated with nonindependence.

### References

Grill J, Kieffer V, Kalifa C: Measuring the neuro-cognitive side-effects of irradiation in children with brain tumors. Pediatr Blood Cancer 42 (5): 452-6, 2004.15049019
Marusak HA, Iadipaolo AS, Harper FW, et al.: Neurodevelopmental consequences of pediatric cancer and its treatment: applying an early adversity framework to understanding cognitive, behavioral, and emotional outcomes. Neuropsychol Rev 28 (2): 123-175, 2018.29270773
Brinkman TM, Krasin MJ, Liu W, et al.: Long-Term Neurocognitive Functioning and Social Attainment in Adult Survivors of Pediatric CNS Tumors: Results From the St Jude Lifetime Cohort Study. J Clin Oncol 34 (12): 1358-67, 2016.26834063
Moxon-Emre I, Bouffet E, Taylor MD, et al.: Impact of craniospinal dose, boost volume, and neurologic complications on intellectual outcome in patients with medulloblastoma. J Clin Oncol 32 (17): 1760-8, 2014.24516024
Krull KR, Zhang N, Santucci A, et al.: Long-term decline in intelligence among adult survivors of childhood acute lymphoblastic leukemia treated with cranial radiation. Blood 122 (4): 550-3, 2013.23744583
Annett RD, Hile S, Bedrick E, et al.: Neuropsychological functioning of children treated for acute lymphoblastic leukemia: impact of whole brain radiation therapy. Psychooncology 24 (2): 181-9, 2015.24890730
van der Plas E, Qiu W, Nieman BJ, et al.: Sex-Specific Associations Between Chemotherapy, Chronic Conditions, and Neurocognitive Impairment in Acute Lymphoblastic Leukemia Survivors: A Report From the Childhood Cancer Survivor Study. J Natl Cancer Inst 113 (5): 588-596, 2021.32882041
Krull KR, Khan RB, Ness KK, et al.: Symptoms of attention-deficit/hyperactivity disorder in long-term survivors of childhood leukemia. Pediatr Blood Cancer 57 (7): 1191-6, 2011.21280202
Kahalley LS, Conklin HM, Tyc VL, et al.: ADHD and secondary ADHD criteria fail to identify many at-risk survivors of pediatric ALL and brain tumor. Pediatr Blood Cancer 57 (1): 110-8, 2011.21337681
Mahajan A, Stavinoha PL, Rongthong W, et al.: Neurocognitive Effects and Necrosis in Childhood Cancer Survivors Treated With Radiation Therapy: A PENTEC Comprehensive Review. Int J Radiat Oncol Biol Phys 119 (2): 401-416, 2024.33810950
Cheung YT, Brinkman TM, Li C, et al.: Chronic Health Conditions and Neurocognitive Function in Aging Survivors of Childhood Cancer: A Report from the Childhood Cancer Survivor Study. J Natl Cancer Inst 110 (4): 411-419, 2018.29088360
Bass JK, Liu W, Banerjee P, et al.: Association of Hearing Impairment With Neurocognition in Survivors of Childhood Cancer. JAMA Oncol 6 (9): 1363-1371, 2020.32729886
Barlow-Krelina E, Chen Y, Yasui Y, et al.: Consistent Physical Activity and Future Neurocognitive Problems in Adult Survivors of Childhood Cancers: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 38 (18): 2041-2052, 2020.32330104
Bernal JDK, Recchia F, Yu DJ, et al.: Physical activity and exercise for cancer-related cognitive impairment among individuals affected by childhood cancer: a systematic review and meta-analysis. Lancet Child Adolesc Health 7 (1): 47-58, 2023.36309037
Phillips NS, Stratton KL, Williams AM, et al.: Late-onset Cognitive Impairment and Modifiable Risk Factors in Adult Childhood Cancer Survivors. JAMA Netw Open 6 (5): e2316077, 2023.37256617
Traunwieser T, Loos E, Ottensmeier H, et al.: Survivors of infant atypical teratoid/rhabdoid tumors present with severely impaired cognitive functions especially for fluid intelligence and visual processing: data from the German brain tumor studies. Pediatr Blood Cancer 71 (5): e30910, 2024.38342954
Merchant TE, Schreiber JE, Wu S, et al.: Critical combinations of radiation dose and volume predict intelligence quotient and academic achievement scores after craniospinal irradiation in children with medulloblastoma. Int J Radiat Oncol Biol Phys 90 (3): 554-61, 2014.25160611
Armstrong GT, Conklin HM, Huang S, et al.: Survival and long-term health and cognitive outcomes after low-grade glioma. Neuro Oncol 13 (2): 223-34, 2011.21177781
Di Pinto M, Conklin HM, Li C, et al.: Learning and memory following conformal radiation therapy for pediatric craniopharyngioma and low-grade glioma. Int J Radiat Oncol Biol Phys 84 (3): e363-9, 2012.22867897
Ris MD, Walsh K, Wallace D, et al.: Intellectual and academic outcome following two chemotherapy regimens and radiotherapy for average-risk medulloblastoma: COG A9961. Pediatr Blood Cancer 60 (8): 1350-7, 2013.23444345
Bowers DC, Liu Y, Leisenring W, et al.: Late-occurring stroke among long-term survivors of childhood leukemia and brain tumors: a report from the Childhood Cancer Survivor Study. J Clin Oncol 24 (33): 5277-82, 2006.17088567
Nassar SL, Conklin HM, Zhou Y, et al.: Neurocognitive outcomes among children who experienced seizures during treatment for acute lymphoblastic leukemia. Pediatr Blood Cancer 64 (8): , 2017.28130818
Torres VA, Ashford JM, Wright E, et al.: The impact of socioeconomic status (SES) on cognitive outcomes following radiotherapy for pediatric brain tumors: a prospective, longitudinal trial. Neuro Oncol 23 (7): 1173-1182, 2021.33543269
Mabbott DJ, Spiegler BJ, Greenberg ML, et al.: Serial evaluation of academic and behavioral outcome after treatment with cranial radiation in childhood. J Clin Oncol 23 (10): 2256-63, 2005.15800316
Brière ME, Scott JG, McNall-Knapp RY, et al.: Cognitive outcome in pediatric brain tumor survivors: delayed attention deficit at long-term follow-up. Pediatr Blood Cancer 50 (2): 337-40, 2008.17458873
Edelstein K, Spiegler BJ, Fung S, et al.: Early aging in adult survivors of childhood medulloblastoma: long-term neurocognitive, functional, and physical outcomes. Neuro Oncol 13 (5): 536-45, 2011.21367970
Palmer SL, Goloubeva O, Reddick WE, et al.: Patterns of intellectual development among survivors of pediatric medulloblastoma: a longitudinal analysis. J Clin Oncol 19 (8): 2302-8, 2001.11304784 21201292
Mulhern RK, Merchant TE, Gajjar A, et al.: Late neurocognitive sequelae in survivors of brain tumours in childhood. Lancet Oncol 5 (7): 399-408, 2004.15231246
Brinkman TM, Reddick WE, Luxton J, et al.: Cerebral white matter integrity and executive function in adult survivors of childhood medulloblastoma. Neuro Oncol 14 (Suppl 4): iv25-36, 2012.23095827
Jacola LM, Ashford JM, Reddick WE, et al.: The relationship between working memory and cerebral white matter volume in survivors of childhood brain tumors treated with conformal radiation therapy. J Neurooncol 119 (1): 197-205, 2014.24847967
Palmer SL, Glass JO, Li Y, et al.: White matter integrity is associated with cognitive processing in patients treated for a posterior fossa brain tumor. Neuro Oncol 14 (9): 1185-93, 2012.22898373
Ali JS, Ashford JM, Swain MA, et al.: Predictors of Cognitive Performance Among Infants Treated for Brain Tumors: Findings From a Multisite, Prospective, Longitudinal Trial. J Clin Oncol 39 (21): 2350-2358, 2021.33945291
Merchant TE, Conklin HM, Wu S, et al.: Late effects of conformal radiation therapy for pediatric patients with low-grade glioma: prospective evaluation of cognitive, endocrine, and hearing deficits. J Clin Oncol 27 (22): 3691-7, 2009.19581535
Liu APY, Hastings C, Wu S, et al.: Treatment burden and long-term health deficits of patients with low-grade gliomas or glioneuronal tumors diagnosed during the first year of life. Cancer 125 (7): 1163-1175, 2019.30620400
Palmer SL, Armstrong C, Onar-Thomas A, et al.: Processing speed, attention, and working memory after treatment for medulloblastoma: an international, prospective, and longitudinal study. J Clin Oncol 31 (28): 3494-500, 2013.23980078
Knight SJ, Conklin HM, Palmer SL, et al.: Working memory abilities among children treated for medulloblastoma: parent report and child performance. J Pediatr Psychol 39 (5): 501-11, 2014.24627465
Schreiber JE, Gurney JG, Palmer SL, et al.: Examination of risk factors for intellectual and academic outcomes following treatment for pediatric medulloblastoma. Neuro Oncol 16 (8): 1129-36, 2014.24497405
Khan RB, Patay Z, Klimo P, et al.: Clinical features, neurologic recovery, and risk factors of postoperative posterior fossa syndrome and delayed recovery: a prospective study. Neuro Oncol 23 (9): 1586-1596, 2021.33823018
Schreiber JE, Palmer SL, Conklin HM, et al.: Posterior fossa syndrome and long-term neuropsychological outcomes among children treated for medulloblastoma on a multi-institutional, prospective study. Neuro Oncol 19 (12): 1673-1682, 2017.29016818
Moxon-Emre I, Taylor MD, Bouffet E, et al.: Intellectual Outcome in Molecular Subgroups of Medulloblastoma. J Clin Oncol 34 (34): 4161-4170, 2016.27507873
Acharya S, Wu S, Ashford JM, et al.: Association between hippocampal dose and memory in survivors of childhood or adolescent low-grade glioma: a 10-year neurocognitive longitudinal study. Neuro Oncol 21 (9): 1175-1183, 2019.30977510
Ellenberg L, Liu Q, Gioia G, et al.: Neurocognitive status in long-term survivors of childhood CNS malignancies: a report from the Childhood Cancer Survivor Study. Neuropsychology 23 (6): 705-17, 2009.19899829
Armstrong GT, Liu Q, Yasui Y, et al.: Long-term outcomes among adult survivors of childhood central nervous system malignancies in the Childhood Cancer Survivor Study. J Natl Cancer Inst 101 (13): 946-58, 2009.19535780
Ris MD, Leisenring WM, Goodman P, et al.: Neuropsychological and socioeconomic outcomes in adult survivors of pediatric low-grade glioma. Cancer 125 (17): 3050-3058, 2019.31231797
Shabason EK, Brodsky C, Baran J, et al.: Clinical diagnosis of attention-deficit/hyperactivity disorder in survivors of pediatric brain tumors. J Neurooncol 143 (2): 305-312, 2019.30982198
Brinkman TM, Palmer SL, Chen S, et al.: Parent-reported social outcomes after treatment for pediatric embryonal tumors: a prospective longitudinal study. J Clin Oncol 30 (33): 4134-40, 2012.23071220
Moyer KH, Willard VW, Gross AM, et al.: The impact of attention on social functioning in survivors of pediatric acute lymphoblastic leukemia and brain tumors. Pediatr Blood Cancer 59 (7): 1290-5, 2012.22848032
Mitby PA, Robison LL, Whitton JA, et al.: Utilization of special education services and educational attainment among long-term survivors of childhood cancer: a report from the Childhood Cancer Survivor Study. Cancer 97 (4): 1115-26, 2003.12569614 22456345
Brinkman TM, Ness KK, Li Z, et al.: Attainment of Functional and Social Independence in Adult Survivors of Pediatric CNS Tumors: A Report From the St Jude Lifetime Cohort Study. J Clin Oncol 36 (27): 2762-2769, 2018.30091946
Kahalley LS, Ris MD, Grosshans DR, et al.: Comparing Intelligence Quotient Change After Treatment With Proton Versus Photon Radiation Therapy for Pediatric Brain Tumors. J Clin Oncol 34 (10): 1043-9, 2016.26811522
Pulsifer MB, Sethi RV, Kuhlthau KA, et al.: Early Cognitive Outcomes Following Proton Radiation in Pediatric Patients With Brain and Central Nervous System Tumors. Int J Radiat Oncol Biol Phys 93 (2): 400-7, 2015.26254679
Kahalley LS, Peterson R, Ris MD, et al.: Superior Intellectual Outcomes After Proton Radiotherapy Compared With Photon Radiotherapy for Pediatric Medulloblastoma. J Clin Oncol 38 (5): 454-461, 2020.31774710
Reddick WE, Glass JO, Helton KJ, et al.: Prevalence of leukoencephalopathy in children treated for acute lymphoblastic leukemia with high-dose methotrexate. AJNR Am J Neuroradiol 26 (5): 1263-9, 2005.15891195
Waber DP, Queally JT, Catania L, et al.: Neuropsychological outcomes of standard risk and high risk patients treated for acute lymphoblastic leukemia on Dana-Farber ALL consortium protocol 95-01 at 5 years post-diagnosis. Pediatr Blood Cancer 58 (5): 758-65, 2012.21721112
Krull KR, Brinkman TM, Li C, et al.: Neurocognitive outcomes decades after treatment for childhood acute lymphoblastic leukemia: a report from the St Jude lifetime cohort study. J Clin Oncol 31 (35): 4407-15, 2013.24190124
Reddick WE, Shan ZY, Glass JO, et al.: Smaller white-matter volumes are associated with larger deficits in attention and learning among long-term survivors of acute lymphoblastic leukemia. Cancer 106 (4): 941-9, 2006.16411228
Kadan-Lottick NS, Zeltzer LK, Liu Q, et al.: Neurocognitive functioning in adult survivors of childhood non-central nervous system cancers. J Natl Cancer Inst 102 (12): 881-93, 2010.20458059
Schuitema I, Deprez S, Van Hecke W, et al.: Accelerated aging, decreased white matter integrity, and associated neuropsychological dysfunction 25 years after pediatric lymphoid malignancies. J Clin Oncol 31 (27): 3378-88, 2013.23960182
Armstrong GT, Reddick WE, Petersen RC, et al.: Evaluation of memory impairment in aging adult survivors of childhood acute lymphoblastic leukemia treated with cranial radiotherapy. J Natl Cancer Inst 105 (12): 899-907, 2013.23584394
Spiegler BJ, Kennedy K, Maze R, et al.: Comparison of long-term neurocognitive outcomes in young children with acute lymphoblastic leukemia treated with cranial radiation or high-dose or very high-dose intravenous methotrexate. J Clin Oncol 24 (24): 3858-64, 2006.16921038
Campbell LK, Scaduto M, Sharp W, et al.: A meta-analysis of the neurocognitive sequelae of treatment for childhood acute lymphocytic leukemia. Pediatr Blood Cancer 49 (1): 65-73, 2007.16628558
Cheung YT, Sabin ND, Reddick WE, et al.: Leukoencephalopathy and long-term neurobehavioural, neurocognitive, and brain imaging outcomes in survivors of childhood acute lymphoblastic leukaemia treated with chemotherapy: a longitudinal analysis. Lancet Haematol 3 (10): e456-e466, 2016.27658980
Jansen NC, Kingma A, Schuitema A, et al.: Neuropsychological outcome in chemotherapy-only-treated children with acute lymphoblastic leukemia. J Clin Oncol 26 (18): 3025-30, 2008.18565888
Iyer NS, Balsamo LM, Bracken MB, et al.: Chemotherapy-only treatment effects on long-term neurocognitive functioning in childhood ALL survivors: a review and meta-analysis. Blood 126 (3): 346-53, 2015.26048910
Jacola LM, Krull KR, Pui CH, et al.: Longitudinal Assessment of Neurocognitive Outcomes in Survivors of Childhood Acute Lymphoblastic Leukemia Treated on a Contemporary Chemotherapy Protocol. J Clin Oncol 34 (11): 1239-47, 2016.26858334
Espy KA, Moore IM, Kaufmann PM, et al.: Chemotherapeutic CNS prophylaxis and neuropsychologic change in children with acute lymphoblastic leukemia: a prospective study. J Pediatr Psychol 26 (1): 1-9, 2001 Jan-Feb.11145727 21066421
Buizer AI, de Sonneville LM, Veerman AJ: Effects of chemotherapy on neurocognitive function in children with acute lymphoblastic leukemia: a critical review of the literature. Pediatr Blood Cancer 52 (4): 447-54, 2009.19061221
Gandy K, Sapkota Y, Scoggins MA, et al.: Genetic variants, neurocognitive outcomes, and functional neuroimaging in survivors of childhood acute lymphoblastic leukemia. JNCI Cancer Spectr 7 (4): , 2023.37285328
Cole PD, Finkelstein Y, Stevenson KE, et al.: Polymorphisms in Genes Related to Oxidative Stress Are Associated With Inferior Cognitive Function After Therapy for Childhood Acute Lymphoblastic Leukemia. J Clin Oncol 33 (19): 2205-11, 2015.25987702
Jacola LM, Edelstein K, Liu W, et al.: Cognitive, behaviour, and academic functioning in adolescent and young adult survivors of childhood acute lymphoblastic leukaemia: a report from the Childhood Cancer Survivor Study. Lancet Psychiatry 3 (10): 965-972, 2016.27639661
Jacola LM, Conklin HM, Krull KR, et al.: The Impact of Intensified CNS-Directed Therapy on Neurocognitive Outcomes in Survivors of Childhood Acute Lymphoblastic Leukemia Treated Without Cranial Irradiation. J Clin Oncol 40 (36): 4218-4227, 2022.36322880
Krull KR, Cheung YT, Liu W, et al.: Chemotherapy Pharmacodynamics and Neuroimaging and Neurocognitive Outcomes in Long-Term Survivors of Childhood Acute Lymphoblastic Leukemia. J Clin Oncol 34 (22): 2644-53, 2016.27269941
Halsey C, Buck G, Richards S, et al.: The impact of therapy for childhood acute lymphoblastic leukaemia on intelligence quotients; results of the risk-stratified randomized central nervous system treatment trial MRC UKALL XI. J Hematol Oncol 4: 42, 2011.21996369
Kadan-Lottick NS, Brouwers P, Breiger D, et al.: A comparison of neurocognitive functioning in children previously randomized to dexamethasone or prednisone in the treatment of childhood acute lymphoblastic leukemia. Blood 114 (9): 1746-52, 2009.19546477
Williams AM, Cheung YT, Hyun G, et al.: Childhood Neurotoxicity and Brain Resilience to Adverse Events during Adulthood. Ann Neurol 89 (3): 534-545, 2021.33274777
Stefanski KJ, Anixt JS, Goodman P, et al.: Long-Term Neurocognitive and Psychosocial Outcomes After Acute Myeloid Leukemia: A Childhood Cancer Survivor Study Report. J Natl Cancer Inst 113 (4): 481-495, 2021.32797189
Edelmann MN, Daryani VM, Bishop MW, et al.: Neurocognitive and Patient-Reported Outcomes in Adult Survivors of Childhood Osteosarcoma. JAMA Oncol 2 (2): 201-8, 2016.26583357
van der Plas E, Darji H, Srivastava DK, et al.: Risk factors for neurocognitive impairment, emotional distress, and poor quality of life in survivors of pediatric rhabdomyosarcoma: A report from the Childhood Cancer Survivor Study. Cancer 130 (12): 2224-2236, 2024.38373075
Tonning Olsson I, Brinkman TM, Wang M, et al.: Neurocognitive and psychosocial outcomes in adult survivors of childhood soft-tissue sarcoma: A report from the St. Jude Lifetime Cohort. Cancer 126 (7): 1576-1584, 2020.31913509
Tonning Olsson I, Brinkman TM, Hyun G, et al.: Neurocognitive outcomes in long-term survivors of Wilms tumor: a report from the St. Jude Lifetime Cohort. J Cancer Surviv 13 (4): 570-579, 2019.31243647
Willard VW, Qaddoumi I, Chen S, et al.: Developmental and adaptive functioning in children with retinoblastoma: a longitudinal investigation. J Clin Oncol 32 (25): 2788-93, 2014.25024069
Willard VW, Qaddoumi I, Pan H, et al.: Cognitive and Adaptive Functioning in Youth With Retinoblastoma: A Longitudinal Investigation Through 10 Years of Age. J Clin Oncol 39 (24): 2676-2684, 2021.33891476
Brinkman TM, Merchant TE, Li Z, et al.: Cognitive function and social attainment in adult survivors of retinoblastoma: a report from the St. Jude Lifetime Cohort Study. Cancer 121 (1): 123-31, 2015.25421884
Ehrhardt MJ, Sandlund JT, Zhang N, et al.: Late outcomes of adult survivors of childhood non-Hodgkin lymphoma: A report from the St. Jude Lifetime Cohort Study. Pediatr Blood Cancer 64 (6): , 2017.27860222
Krull KR, Sabin ND, Reddick WE, et al.: Neurocognitive function and CNS integrity in adult survivors of childhood hodgkin lymphoma. J Clin Oncol 30 (29): 3618-24, 2012.22949149
Hesko C, Liu W, Srivastava DK, et al.: Neurocognitive outcomes in adult survivors of neuroblastoma: A report from the Childhood Cancer Survivor Study. Cancer 129 (18): 2904-2914, 2023.37199722
Wu NL, Phipps AI, Krull KR, et al.: Long-term patient-reported neurocognitive outcomes in adult survivors of hematopoietic cell transplant. Blood Adv 6 (14): 4347-4356, 2022.35584396
Willard VW, Leung W, Huang Q, et al.: Cognitive outcome after pediatric stem-cell transplantation: impact of age and total-body irradiation. J Clin Oncol 32 (35): 3982-8, 2014.25385724
Kenborg L, Winther JF, Linnet KM, et al.: Neurologic disorders in 4858 survivors of central nervous system tumors in childhood-an Adult Life after Childhood Cancer in Scandinavia (ALiCCS) study. Neuro Oncol 21 (1): 125-136, 2019.29850875
Wells EM, Ullrich NJ, Seidel K, et al.: Longitudinal assessment of late-onset neurologic conditions in survivors of childhood central nervous system tumors: a Childhood Cancer Survivor Study report. Neuro Oncol 20 (1): 132-142, 2018.29016809
Goldsby RE, Liu Q, Nathan PC, et al.: Late-occurring neurologic sequelae in adult survivors of childhood acute lymphoblastic leukemia: a report from the Childhood Cancer Survivor Study. J Clin Oncol 28 (2): 324-31, 2010.19917844
Phillips NS, Khan RB, Li C, et al.: Seizures' impact on cognition and quality of life in childhood cancer survivors. Cancer 128 (1): 180-191, 2022.34468985
Jain P, Gulati S, Seth R, et al.: Vincristine-induced neuropathy in childhood ALL (acute lymphoblastic leukemia) survivors: prevalence and electrophysiological characteristics. J Child Neurol 29 (7): 932-7, 2014.23781018
Ness KK, Jones KE, Smith WA, et al.: Chemotherapy-related neuropathic symptoms and functional impairment in adult survivors of extracranial solid tumors of childhood: results from the St. Jude Lifetime Cohort Study. Arch Phys Med Rehabil 94 (8): 1451-7, 2013.23537607
Kandula T, Farrar MA, Cohn RJ, et al.: Chemotherapy-Induced Peripheral Neuropathy in Long-term Survivors of Childhood Cancer: Clinical, Neurophysiological, Functional, and Patient-Reported Outcomes. JAMA Neurol 75 (8): 980-988, 2018.29799906
Rodwin RL, Ross WL, Rotatori J, et al.: Newly identified chemotherapy-induced peripheral neuropathy in a childhood cancer survivorship clinic. Pediatr Blood Cancer 69 (3): e29550, 2022.34971076
Varedi M, Lu L, Howell CR, et al.: Peripheral Neuropathy, Sensory Processing, and Balance in Survivors of Acute Lymphoblastic Leukemia. J Clin Oncol 36 (22): 2315-2322, 2018.29812998
Gurney JG, Kadan-Lottick NS, Packer RJ, et al.: Endocrine and cardiovascular late effects among adult survivors of childhood brain tumors: Childhood Cancer Survivor Study. Cancer 97 (3): 663-73, 2003.12548609 22434840
Ullrich NJ, Robertson R, Kinnamon DD, et al.: Moyamoya following cranial irradiation for primary brain tumors in children. Neurology 68 (12): 932-8, 2007.17372129
Wang C, Roberts KB, Bindra RS, et al.: Delayed cerebral vasculopathy following cranial radiation therapy for pediatric tumors. Pediatr Neurol 50 (6): 549-56, 2014.24739378
Mueller S, Fullerton HJ, Stratton K, et al.: Radiation, atherosclerotic risk factors, and stroke risk in survivors of pediatric cancer: a report from the Childhood Cancer Survivor Study. Int J Radiat Oncol Biol Phys 86 (4): 649-55, 2013.23680033
Reulen RC, Guha J, Bright CJ, et al.: Risk of cerebrovascular disease among 13 457 five-year survivors of childhood cancer: A population-based cohort study. Int J Cancer 148 (3): 572-583, 2021.32683688
Fullerton HJ, Stratton K, Mueller S, et al.: Recurrent stroke in childhood cancer survivors. Neurology 85 (12): 1056-64, 2015.26311747
Waxer JF, Wong K, Modiri A, et al.: Risk of Cerebrovascular Events Among Childhood and Adolescent Patients Receiving Cranial Radiation Therapy: A PENTEC Normal Tissue Outcomes Comprehensive Review. Int J Radiat Oncol Biol Phys 119 (2): 417-430, 2024.36057476
Khan RB, Merchant TE, Sadighi ZS, et al.: Prevalence, risk factors, and response to treatment for hypersomnia of central origin in survivors of childhood brain tumors. J Neurooncol 136 (2): 379-384, 2018.29116485
van Kooten JAMC, Maurice-Stam H, Schouten AYN, et al.: High occurrence of sleep problems in survivors of a childhood brain tumor with neurocognitive complaints: The association with psychosocial and behavioral executive functioning. Pediatr Blood Cancer 66 (11): e27947, 2019.31418996
Khan RB, Hudson MM, Ledet DS, et al.: Neurologic morbidity and quality of life in survivors of childhood acute lymphoblastic leukemia: a prospective cross-sectional study. J Cancer Surviv 8 (4): 688-96, 2014.25008582
Khong PL, Leung LH, Fung AS, et al.: White matter anisotropy in post-treatment childhood cancer survivors: preliminary evidence of association with neurocognitive function. J Clin Oncol 24 (6): 884-90, 2006.16484697
Zeller B, Tamnes CK, Kanellopoulos A, et al.: Reduced neuroanatomic volumes in long-term survivors of childhood acute lymphoblastic leukemia. J Clin Oncol 31 (17): 2078-85, 2013.23589559
Faraci M, Morana G, Bagnasco F, et al.: Magnetic resonance imaging in childhood leukemia survivors treated with cranial radiotherapy: a cross sectional, single center study. Pediatr Blood Cancer 57 (2): 240-6, 2011.21671360
Phillips NS, Hillenbrand CM, Mitrea BG, et al.: Cerebral microbleeds in adult survivors of childhood acute lymphoblastic leukemia treated with cranial radiation. Sci Rep 10 (1): 692, 2020.31959839
Rodwin RL, Chen Y, Yasui Y, et al.: Longitudinal Evaluation of Neuromuscular Dysfunction in Long-term Survivors of Childhood Cancer: A Report from the Childhood Cancer Survivor Study. Cancer Epidemiol Biomarkers Prev 30 (8): 1536-1545, 2021.34099519
Rodwin RL, Wang F, Lu L, et al.: Motor and sensory impairment in survivors of childhood central nervous system (CNS) tumors in the St. Jude Lifetime Cohort (SJLIFE). Cancer Med 13 (14): e7422, 2024.39056576
Cooper BT, Mayo CS, Milano MT, et al.: Predictive Factors Associated With Radiation Myelopathy in Pediatric Patients With Cancer: A PENTEC Comprehensive Review. Int J Radiat Oncol Biol Phys 119 (2): 494-506, 2024.38323945
Ness KK, Hudson MM, Jones KE, et al.: Effect of Temporal Changes in Therapeutic Exposure on Self-reported Health Status in Childhood Cancer Survivors. Ann Intern Med 166 (2): 89-98, 2017.27820947
Ernst M, Hinz A, Brähler E, et al.: Quality of life after pediatric cancer: comparison of long-term childhood cancer survivors' quality of life with a representative general population sample and associations with physical health and risk indicators. Health Qual Life Outcomes 21 (1): 65, 2023.37403085
Schulte F, Brinkman TM, Li C, et al.: Social adjustment in adolescent survivors of pediatric central nervous system tumors: A report from the Childhood Cancer Survivor Study. Cancer 124 (17): 3596-3608, 2018.30067866
Vuotto SC, Wang M, Okcu MF, et al.: Neurologic morbidity and functional independence in adult survivors of childhood cancer. Ann Clin Transl Neurol 11 (2): 291-301, 2024.38013658
Hörnquist L, Rickardsson J, Lannering B, et al.: Altered self-perception in adult survivors treated for a CNS tumor in childhood or adolescence: population-based outcomes compared with the general population. Neuro Oncol 17 (5): 733-40, 2015.25332406
Schulte F, Barrera M: Social competence in childhood brain tumor survivors: a comprehensive review. Support Care Cancer 18 (12): 1499-513, 2010.20680353
Papini C, Willard VW, Gajjar A, et al.: Social cognition and adjustment in adult survivors of pediatric central nervous system tumors. Cancer 129 (19): 3064-3075, 2023.37329245
Bonneau J, Berbis J, Michel G, et al.: Adolescence and Socioeconomic Factors: Key Factors in the Long-Term Impact of Leukemia on Scholastic Performance-A LEA Study. J Pediatr 205: 168-175.e2, 2019.30442413
Drabbe C, Coenraadts ES, van Houdt WJ, et al.: Impaired social functioning in adolescent and young adult sarcoma survivors: Prevalence and risk factors. Cancer 129 (9): 1419-1431, 2023.36787112
Ernst M, Brähler E, Wild PS, et al.: Risk factors for suicidal ideation in a large, registry-based sample of adult long-term childhood cancer survivors. J Affect Disord 265: 351-356, 2020.32090759
Lubas MM, Mirzaei Salehabadi S, Lavecchia J, et al.: Suicidality among adult survivors of childhood cancer: A report from the St. Jude Lifetime Cohort Study. Cancer 126 (24): 5347-5355, 2020.32964427
Brinkman TM, Zhang N, Recklitis CJ, et al.: Suicide ideation and associated mortality in adult survivors of childhood cancer. Cancer 120 (2): 271-7, 2014.24122148
Gunnes MW, Lie RT, Bjørge T, et al.: Suicide and violent deaths in survivors of cancer in childhood, adolescence and young adulthood-A national cohort study. Int J Cancer 140 (3): 575-580, 2017.27750385
Sun CL, Francisco L, Baker KS, et al.: Adverse psychological outcomes in long-term survivors of hematopoietic cell transplantation: a report from the Bone Marrow Transplant Survivor Study (BMTSS). Blood 118 (17): 4723-31, 2011.21821714
Vuotto SC, Krull KR, Li C, et al.: Impact of chronic disease on emotional distress in adult survivors of childhood cancer: A report from the Childhood Cancer Survivor Study. Cancer 123 (3): 521-528, 2017.27764524
Zheng DJ, Krull KR, Chen Y, et al.: Long-term psychological and educational outcomes for survivors of neuroblastoma: A report from the Childhood Cancer Survivor Study. Cancer 124 (15): 3220-3230, 2018.29888538
Recklitis C, O'Leary T, Diller L: Utility of routine psychological screening in the childhood cancer survivor clinic. J Clin Oncol 21 (5): 787-92, 2003.12610175 22497224
Hsu TW, Liang CS, Tsai SJ, et al.: Risk of Major Psychiatric Disorders Among Children and Adolescents Surviving Malignancies: A Nationwide Longitudinal Study. J Clin Oncol 41 (11): 2054-2066, 2023.36649568
De R, Sutradhar R, Kurdyak P, et al.: Incidence and Predictors of Mental Health Outcomes Among Survivors of Adolescent and Young Adult Cancer: A Population-Based Study Using the IMPACT Cohort. J Clin Oncol 39 (9): 1010-1019, 2021.33492982
Phipps S, Klosky JL, Long A, et al.: Posttraumatic stress and psychological growth in children with cancer: has the traumatic impact of cancer been overestimated? J Clin Oncol 32 (7): 641-6, 2014.24449230
Stuber ML, Meeske KA, Leisenring W, et al.: Defining medical posttraumatic stress among young adult survivors in the Childhood Cancer Survivor Study. Gen Hosp Psychiatry 33 (4): 347-53, 2011 Jul-Aug.21762831
Phipps S, Larson S, Long A, et al.: Adaptive style and symptoms of posttraumatic stress in children with cancer and their parents. J Pediatr Psychol 31 (3): 298-309, 2006.15917493
Phipps S, Jurbergs N, Long A: Symptoms of post-traumatic stress in children with cancer: does personality trump health status? Psychooncology 18 (9): 992-1002, 2009.19177432
Rourke MT, Hobbie WL, Schwartz L, et al.: Posttraumatic stress disorder (PTSD) in young adult survivors of childhood cancer. Pediatr Blood Cancer 49 (2): 177-82, 2007.16862538
Schwartz L, Drotar D: Posttraumatic stress and related impairment in survivors of childhood cancer in early adulthood compared to healthy peers. J Pediatr Psychol 31 (4): 356-66, 2006.15788716
Stuber ML, Meeske KA, Krull KR, et al.: Prevalence and predictors of posttraumatic stress disorder in adult survivors of childhood cancer. Pediatrics 125 (5): e1124-34, 2010.20435702
Hobbie WL, Stuber M, Meeske K, et al.: Symptoms of posttraumatic stress in young adult survivors of childhood cancer. J Clin Oncol 18 (24): 4060-6, 2000.11118467 20569285
Dieluweit U, Debatin KM, Grabow D, et al.: Social outcomes of long-term survivors of adolescent cancer. Psychooncology 19 (12): 1277-84, 2010.20140879
Seitz DC, Hagmann D, Besier T, et al.: Life satisfaction in adult survivors of cancer during adolescence: what contributes to the latter satisfaction with life? Qual Life Res 20 (2): 225-36, 2011.20844965
Tai E, Buchanan N, Townsend J, et al.: Health status of adolescent and young adult cancer survivors. Cancer 118 (19): 4884-91, 2012.22688896
Schultz KA, Ness KK, Whitton J, et al.: Behavioral and social outcomes in adolescent survivors of childhood cancer: a report from the childhood cancer survivor study. J Clin Oncol 25 (24): 3649-56, 2007.17704415
Prasad PK, Hardy KK, Zhang N, et al.: Psychosocial and Neurocognitive Outcomes in Adult Survivors of Adolescent and Early Young Adult Cancer: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 33 (23): 2545-52, 2015.26150441
Brinkman TM, Li C, Vannatta K, et al.: Behavioral, Social, and Emotional Symptom Comorbidities and Profiles in Adolescent Survivors of Childhood Cancer: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 34 (28): 3417-25, 2016.27432919
Karlson CW, Alberts NM, Liu W, et al.: Longitudinal pain and pain interference in long-term survivors of childhood cancer: A report from the Childhood Cancer Survivor Study. Cancer 126 (12): 2915-2923, 2020.32227649
Tonning Olsson I, Alberts NM, Li C, et al.: Pain and functional outcomes in adult survivors of childhood cancer: A report from the St. Jude Lifetime Cohort study. Cancer 127 (10): 1679-1689, 2021.33369896
Frederiksen LE, Erdmann F, Mader L, et al.: Psychiatric disorders in childhood cancer survivors in Denmark, Finland, and Sweden: a register-based cohort study from the SALiCCS research programme. Lancet Psychiatry 9 (1): 35-45, 2022.34822758
Papini C, Mirzaei S S, Xing M, et al.: Evolving therapies, neurocognitive outcomes, and functional independence in adult survivors of childhood glioma. J Natl Cancer Inst 116 (2): 288-298, 2024.37688569

## Late Effects of the Digestive System

### Dental

#### Overview

Chemotherapy, radiation therapy, and surgery can result in cosmetic and functional abnormalities of the oral cavity and dentition. The quality of current evidence regarding this outcome is limited by retrospective data collection, small sample size, cohort selection and participation bias, and heterogeneity in treatment approach, time since treatment, and method of ascertainment.

Oral and dental complications reported in childhood cancer survivors include the following:

- Abnormalities of tooth development.
- Salivary gland dysfunction.
- Abnormalities of craniofacial development.
- Osteoradionecrosis.
- Second cancers in the oral cavity.

#### Abnormalities of tooth development

Abnormalities of dental development reported in childhood cancer survivors include the following:[1-12]

- Absence of tooth development.
- Microdontia.
- Enamel hypoplasia.
- Root malformation.
- Hypodontia.

The prevalence of hypodontia has varied widely in series depending on age at diagnosis, treatment modality, and method of ascertainment.

Cancer treatments that have been associated with dental maldevelopment include the following:[3,10]

- Head and neck radiation therapy.
- Any chemotherapy.
- Hematopoietic stem cell transplant (HSCT).

Children younger than 5 years are at greatest risk of dental anomalies, including root agenesis, delayed eruption, enamel defects, and/or excessive caries related to disruption of ameloblast (enamel producing) and odontoblast (dentin producing) activity early in life.[3]

Key findings related to cancer treatment effect on tooth development include the following:

##### Radiation therapy

- Radiation directed at the oral cavity or surrounding structures increases the risk of dental anomalies because ameloblasts can be permanently damaged by doses as low as 10 Gy. In addition, salivary function is impacted by exposure to major and minor glands.[3-5]
- The most significant degree of tooth aplasia or delayed eruption occurs in younger children (aged <4 years) who are exposed to radiation doses of 20 Gy or higher.[13]
- Developing teeth may be irradiated when treating head and neck sarcomas, Hodgkin lymphoma, neuroblastoma, central nervous system leukemia, nasopharyngeal cancer, and brain tumors, or during total-body irradiation (TBI) for HSCT.
- Doses of 10 Gy to 40 Gy can cause root shortening or abnormal curvature, dwarfism, and hypocalcification.[14]
- Significant dental abnormalities, including mandibular or maxillary hypoplasia, increased caries, hypodontia, microdontia, root stunting, and xerostomia have been reported in more than 85% of survivors of head and neck rhabdomyosarcoma treated with radiation doses higher than 40 Gy.[4,15]
- In the St. Jude Life (SJLIFE) cohort, survivors who received radiation therapy that potentially exposed the oral cavity were more likely to report at least one dental health problem (odds ratio [OR], 1.48; 95% confidence interval [CI], 1.26–1.72) and at least one soft tissue abnormality (OR, 1.52; 95% CI, 1.25–1.84) after controlling for socioeconomic factors, age at last follow-up and diagnosis, other treatment exposures, and access to dental services.[12]

##### Chemotherapy

- Chemotherapy, especially exposure to alkylating agents, can affect tooth development.[3,5,6]
- Chemotherapy for the treatment of leukemia or neuroblastoma is associated with shortening and thinning of the premolar roots and enamel abnormalities.[8,16,17]
- Childhood Cancer Survivor Study (CCSS) investigators identified age younger than 5 years and increased exposure to cyclophosphamide as significant risk factors for developmental dental abnormalities in long-term survivors of childhood cancer.[3]
- In the SJLIFE study, survivors who received classic alkylating agents (OR, 1.6; 95% CI, 1.36–1.88) or anthracycline antibiotics (OR, 1.22; 95% CI, 1.04–1.42) were more likely to report at least one dental health problem after controlling for socioeconomic factors, age at last follow-up and diagnosis, other treatment exposures, and access to dental services.[12]

##### HSCT

- HSCT conditioning, especially regimens containing TBI, may result in tooth agenesis and root malformation.[1,2]
- Younger children who have not developed secondary teeth are most vulnerable.[1,2,5]
- Children who undergo HSCT with TBI may develop short V-shaped roots, microdontia, enamel hypoplasia, and/or premature apical closure.[1,2,7]
- Younger age at HSCT is associated with greater severity in dental maldevelopment and deficit in vertical growth of the lower face.[8]
- Dental abnormalities have been reported in patients who underwent HSCT without TBI, particularly in patients younger than 2 years at the time of the transplant.[17]

#### Salivary gland dysfunction

Xerostomia, the sensation of dry mouth, is a potential side effect after head and neck irradiation or HSCT that can severely impact quality of life.[18]

- Complications of reduced salivary secretion include the following:[18,19]
  - Increased caries.
  - Susceptibility to oral infections.
  - Sleep disturbances.
  - Difficulties with chewing, swallowing, and speaking.
- The prevalence of salivary gland dysfunction after cancer treatment varies based on measurement techniques (patient report vs. stimulated or unstimulated salivary secretion rates).[20]
- In general, the prevalence of self-reported persistent posttherapy xerostomia is low among childhood cancer survivors.
- In the CCSS, the prevalence of self-reported xerostomia in survivors was 2.8% compared with 0.3% in siblings, with an increased risk in survivors older than 30 years.[3]

Key findings related to cancer treatment effect on salivary gland function include the following:

##### Radiation therapy

- Salivary gland irradiation incidental to treatment of head and neck malignancies or Hodgkin lymphoma causes a qualitative and quantitative change in salivary flow, which can be reversible after doses of lower than 40 Gy but may be irreversible after higher doses, depending on whether sensitizing chemotherapy is also administered.[18]
- In a German study of 114 pediatric patients, the risk of acute and late xerostomia increased with parotid and submandibular gland dose. In general, grade 1 or higher xerostomia was seen in patients who received a maximum dose of higher than 20 Gy to the salivary glands. The odds of both acute and late xerostomia were higher in patients who received concurrent chemotherapy compared with those who received radiation therapy alone, with an OR for acute xerostomia of 3.64 (95% CI, 1.49–8.89) and for late xerostomia of 5.15 (95% CI, 1.20–22.15).[21]
- The Pediatric Normal Tissue Effects in the Clinic (PENTEC) initiative reported on late effects for childhood cancer survivors who were treated with radiation therapy for head and neck cancers.[22] Grades 1 or higher xerostomia were seen in patients who received a maximum dose of more than 20 Gy to the salivary glands. The odds of both acute and chronic xerostomia were greater in patients who had received concurrent chemotherapy and radiation therapy (acute xerostomia OR, 3.64; 95% CI, 1.49–8.89 and late xerostomia OR, 5.15; 95% CI, 1.20–22.15), compared with patients who were treated with radiation therapy alone. A mean parotid dose of 35 to 40 Gy was associated with a 32% risk of higher than grade 2 acute xerostomia and a 13% to 32% risk of chronic xerostomia.

##### HSCT

- HSCT recipients are at increased risk of salivary gland dysfunction related to transplant conditioning or graft-versus-host disease (GVHD).
- GVHD can cause hyposalivation and xerostomia with resultant dental disease.
- In a study of pediatric HSCT survivors, 60% of those exposed to a conditioning regimen with cyclophosphamide and 10 Gy single-dose TBI had decreased salivary secretion rates, compared with 26% of those who received cyclophosphamide and busulfan.[23]
- In another study, the prevalence of reduced salivary secretion did not differ among long-term survivors on the basis of the conditioning regimen (single-dose TBI, 47%; fractionated TBI, 47%; busulfan, 42%).[24]

##### Chemotherapy

- The association of chemotherapy alone with xerostomia remains controversial.[18]
- Only one study of pediatric patients demonstrated an excess risk (OR, 12.32; 95% CI, 2.1–74.4) of decreased stimulated saliva flow rates among patients treated with cyclophosphamide. However, an increase in dental caries was not noted and patient-reported xerostomia was not evaluated.[6]

#### Abnormalities of craniofacial development

- Craniofacial maldevelopment is a common adverse outcome among children treated with high-dose radiation therapy to the head and neck that frequently occurs in association with other oral cavity sequelae such as dental anomalies, xerostomia, and trismus.[4,25]
- The extent and severity of musculoskeletal disfigurement is related to age at treatment and radiation therapy volume and dose, with higher risk observed among younger patients and those who received 30 Gy or higher of radiation therapy.[25]

#### Other oral health complications

- Osteoradionecrosis of the jaw is a rare complication observed in childhood survivors treated with high-dose craniofacial radiation (>40 Gy), particularly after dental extractions in irradiated mandibles.[26,27]
- Remediation of cosmetic and functional abnormalities often requires multiple surgical interventions.
- The impact of infectious complications and alterations in the microflora during and after therapy is not known.[5]

#### Posttherapy management

- Some studies suggest that fluoride products or chlorhexidine rinses may be beneficial in patients who have undergone radiation therapy.[28]
- Dental caries are a problematic consequence of reduced salivary quality and flow. The use of topical fluoride can dramatically reduce the frequency of caries, and saliva substitutes and sialagogues can ameliorate sequelae such as xerostomia.[19]

For more information about oral complications in cancer patients, see Oral Complications of Cancer Therapies.

Table 5 summarizes oral and dental late effects and the related health screenings.

Table 5. Oral/Dental Late Effects^a^

Predisposing Therapy | Oral/Dental Effects | Health Screening/Interventions
Any chemotherapy; radiation exposing oral cavity | Dental developmental abnormalities; tooth/root agenesis; microdontia; root thinning/shortening; enamel dysplasia | Dental evaluation and cleaning every 6 months
Any chemotherapy; radiation exposing oral cavity | Dental developmental abnormalities; tooth/root agenesis; microdontia; root thinning/shortening; enamel dysplasia | Regular dental care including fluoride applications
Any chemotherapy; radiation exposing oral cavity | Dental developmental abnormalities; tooth/root agenesis; microdontia; root thinning/shortening; enamel dysplasia | Consultation with orthodontist experienced in management of irradiated childhood cancer survivors
Any chemotherapy; radiation exposing oral cavity | Dental developmental abnormalities; tooth/root agenesis; microdontia; root thinning/shortening; enamel dysplasia | Baseline Panorex x-ray before dental procedures to evaluate root development
Radiation exposing oral cavity | Malocclusion; temporomandibular joint dysfunction | Dental evaluation and cleaning every 6 months
Radiation exposing oral cavity | Malocclusion; temporomandibular joint dysfunction | Regular dental care including fluoride applications
Radiation exposing oral cavity | Malocclusion; temporomandibular joint dysfunction | Consultation with orthodontist experienced in management of irradiated childhood cancer survivors
Radiation exposing oral cavity | Malocclusion; temporomandibular joint dysfunction | Baseline Panorex x-ray before dental procedures to evaluate root development
Radiation exposing oral cavity | Malocclusion; temporomandibular joint dysfunction | Referral to otolaryngologist for assistive devices for jaw opening
Radiation exposing oral cavity; HSCT with history of chronic GVHD | Xerostomia/salivary gland dysfunction; periodontal disease; dental caries; oral cancer (squamous cell carcinoma) | Dental evaluation and cleaning every 6 months
Radiation exposing oral cavity; HSCT with history of chronic GVHD | Xerostomia/salivary gland dysfunction; periodontal disease; dental caries; oral cancer (squamous cell carcinoma) | Supportive care with saliva substitutes, moistening agents, and sialogogues (pilocarpine)
Radiation exposing oral cavity; HSCT with history of chronic GVHD | Xerostomia/salivary gland dysfunction; periodontal disease; dental caries; oral cancer (squamous cell carcinoma) | Regular dental care including fluoride applications
Radiation exposing oral cavity; HSCT with history of chronic GVHD | Xerostomia/salivary gland dysfunction; periodontal disease; dental caries; oral cancer (squamous cell carcinoma) | Referral for biopsy of suspicious lesions
Radiation exposing oral cavity (≥40 Gy) | Osteoradionecrosis | History: impaired or delayed healing after dental work
Radiation exposing oral cavity (≥40 Gy) | Osteoradionecrosis | Examination: persistent jaw pain, swelling or trismus
Radiation exposing oral cavity (≥40 Gy) | Osteoradionecrosis | Imaging studies (x-ray, CT scan and/or MRI) may assist in making diagnosis
Radiation exposing oral cavity (≥40 Gy) | Osteoradionecrosis | Surgical biopsy may be needed to confirm diagnosis
Radiation exposing oral cavity (≥40 Gy) | Osteoradionecrosis | Consider hyperbaric oxygen treatments

CT = computed tomography; GVHD = graft-versus-host disease; HSCT = hematopoietic stem cell transplant; MRI = magnetic resonance imaging.

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### Digestive Tract

#### Overview

The gastrointestinal (GI) tract is sensitive to the acute toxicities of chemotherapy, radiation therapy, and surgery. These important treatment modalities can also result in some long-term issues in a treatment- and dose-dependent manner.

Reports published about long-term GI tract outcomes are limited by retrospective data collection, small sample size, cohort selection and participation bias, heterogeneity in treatment approach, time since treatment, and method of ascertainment.

Treatment-related late effects include the following:

- Upper and lower digestive tract late effects associated with dose intensity of chemotherapy and/or abdominal radiation.
- Adhesions secondary to abdominal surgery predisposing to postoperative bowel obstruction.

Digestive tract–related late effects include the following:

- Esophageal dysmotility.
- Esophageal stricture.
- Gastroesophageal reflux.
- Gastritis, enteritis, or colitis.
- GI motility dysfunction (diarrhea, constipation, encopresis, bowel obstruction).
- Subsequent malignant neoplasms (SMNs).

#### Impact of cancer histology on GI outcomes

The abdomen is a relatively common location for several pediatric malignancies, including rhabdomyosarcoma, Wilms tumor, lymphoma, germ cell tumors, and neuroblastoma.

Intra-abdominal tumors often require multimodal therapy, occasionally necessitating resection of bowel, bowel-injuring chemotherapy, and/or radiation therapy. Thus, these tumors would be expected to be particularly prone to long-term digestive tract issues.

#### GI outcomes from selected cohort studies

Evidence (GI outcomes from selected cohort studies):

1. Among 5-year childhood cancer survivors participating in the CCSS, the cumulative incidence of self-reported GI conditions was 37.6% at 20 years from cancer diagnosis (25.8% for upper GI complications and 15.5% for lower GI complications), representing an almost twofold excess risk of upper GI complications (relative risk [RR], 1.8; 95% CI, 1.6–2.0) and lower GI complications (RR, 1.9; 95% CI, 1.7–2.2), compared with sibling controls.[29]
  Factors predicting higher risk of specific GI complications include the following:
  - Older age at diagnosis.
  - Intensified therapy (anthracyclines for upper GI complications and alkylating agents for lower GI complications).
  - Abdominal radiation therapy.
  - Abdominal surgery.

#### Radiation-related GI injury

- Late radiation injury to the digestive tract is attributable to vascular injury.
- Necrosis, ulceration, stenosis, or perforation can occur and are characterized by malabsorption, pain, and recurrent episodes of bowel obstruction, as well as perforation and infection.[30-32]
- In general, fractionated radiation doses of 20 Gy to 30 Gy can be delivered to the small bowel without significant long-term morbidity.[33]
- Doses higher than 40 Gy are associated with a greater risk of bowel obstruction or chronic enterocolitis.[33]
- Sensitizing chemotherapeutic agents such as dactinomycin or anthracyclines can increase this risk.

A limited number of reports describe GI complications in pediatric patients with genitourinary solid tumors treated with radiation therapy:

1. The CCSS evaluated the long-term morbidity among unilateral, nonsyndromic Wilms tumor survivors (n = 2,008) according to conventional treatment regimens. All patients underwent unilateral nephrectomy.[34]
  - The 35-year cumulative incidence for intestinal obstruction was 8.1% (95% CI, 6.6%–9.6%).
  - Relative to siblings, survivors treated with vincristine and actinomycin D (VA) demonstrated an elevated risk of intestinal obstruction (RR, 9.4). The risk with VA treatment was lower than for treatment groups who received more intensive therapy (RR range, 15.4–46.8).
  - The rate of intestinal obstruction was highest among survivors who received more than 20 Gy of whole abdomen or flank radiation therapy.
2. The CCSS evaluated the incidence and risk of late-occurring intestinal obstruction requiring surgery in 12,316 5-year survivors (2,002 with and 10,314 without abdominopelvic tumors) and 4,023 siblings.[35]
  - The most common diagnoses among survivors with abdominopelvic tumors were Wilms tumors and neuroblastomas but also included soft tissue sarcomas, lymphomas, and bone tumors.
  - The cumulative incidence of late intestinal obstruction requiring surgery at 35 years was 5.8% among survivors with abdominopelvic tumors, 1.0% among those without abdominopelvic tumors, and 0.3% among siblings.
  - Elevated risk of intestinal obstruction requiring surgery was associated with presence of an abdominopelvic tumor (adjusted rate ratio [ARR], 3.6; P < .001) and exposure to abdominal or pelvic radiation therapy within 5 years of cancer diagnosis (ARR, 2.4; P < .001).
  - Among survivors of abdominopelvic tumors, the median time from diagnosis to the first late intestinal obstruction requiring surgery was 12 years (range, 8–19 years).
  - Lymphoma resulted in the highest cumulative incidence of late-occurring intestinal obstruction that required surgery (7.2% at 35 years after diagnosis).
3. The CCSS evaluated late-onset anorectal disease in cohort members:[36]
  - Among survivors, pelvic radiation therapy higher than 30 Gy within 5 years of cancer diagnosis was associated with late-onset anorectal disease (ARR for 30–49.9 Gy vs. none, 1.6; ARR for ≥50 Gy vs. none, 5.4).
  - The most frequent anorectal disease reported was fistula, followed by stricture and anorectal SMN.
  - Late-onset anorectal disease was associated with psychological impairment in all domains, as characterized by increased emotional distress and impaired quality of life.
4. Reports from the Intergroup Rhabdomyosarcoma Study evaluating GI toxicity in long-term survivors of genitourinary rhabdomyosarcoma infrequently observed abnormalities of the irradiated bowel.[37-39]
  - Radiation-related complications occurred in approximately 10% of long-term survivors of paratesticular and bladder/prostate rhabdomyosarcoma and included intraperitoneal adhesions with bowel obstruction, chronic diarrhea, and stricture or enteric fistula formation.
5. The CCSS evaluated the prevalence of esophageal stricture and identified associated clinical and treatment risk factors among 17,121 5-year childhood cancer survivors and 3,400 siblings.[40]
  - The prevalence of esophageal stricture among survivors was 2.0% (95% CI, 1.8%–2.2%), representing a 7.6-fold increased risk compared with siblings.
  - Factors significantly associated with risk of esophageal stricture included a diagnosis of Hodgkin lymphoma, greater chest radiation dose, younger age at cancer diagnosis, platinum chemotherapy exposure, and undergoing an HSCT.

Table 6 summarizes digestive tract late effects and the related health screenings.

Table 6. Digestive Tract Late Effects^a^

Predisposing Therapy | Gastrointestinal Effects | Health Screening/Interventions
Radiation exposing esophagus; HSCT with any history of chronic GVHD | Gastroesophageal reflux; esophageal dysmotility; esophageal stricture | History: dysphagia, heart burn
Radiation exposing esophagus; HSCT with any history of chronic GVHD | Gastroesophageal reflux; esophageal dysmotility; esophageal stricture | Esophageal dilation, medical management, antireflux surgery
Radiation exposing bowel | Chronic enterocolitis; fistula; strictures | History: nausea, vomiting, abdominal pain, diarrhea
Radiation exposing bowel | Chronic enterocolitis; fistula; strictures | Serum protein and albumin levels yearly in patients with chronic diarrhea or fistula; gastroenterology consultation
Radiation exposing bowel | Chronic enterocolitis; fistula; strictures | Surgical and/or gastroenterology consultation for symptomatic patients
Radiation exposing bowel; laparotomy | Bowel obstruction | History: abdominal pain, distention, vomiting, constipation
Radiation exposing bowel; laparotomy | Bowel obstruction | Examination: tenderness, abdominal guarding, distension (acute episode)
Radiation exposing bowel; laparotomy | Bowel obstruction | Clinical evaluation in patients with symptoms of obstruction
Radiation exposing bowel; laparotomy | Bowel obstruction | Surgical consultation in patients unresponsive to medical management
Pelvic surgery; cystectomy | Fecal incontinence | History: chronic constipation, fecal soiling
Pelvic surgery; cystectomy | Fecal incontinence | Rectal examination

GVHD = graft-versus-host disease; HSCT = hematopoietic stem cell transplant; KUB = kidneys, ureter, bladder (plain abdominal radiograph).

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### Hepatobiliary

#### Overview

Hepatic complications resulting from childhood cancer therapy are observed primarily as acute treatment toxicities.[41] Because many chemotherapy agents and radiation are hepatotoxic, transient liver function anomalies are common during therapy. Severe acute hepatic complications rarely occur. Survivors of childhood cancer can occasionally exhibit long-standing hepatic injury.[42]

Some general concepts regarding hepatotoxicity related to childhood cancer include the following:

- The risk of long-term hepatotoxicity is not well defined.
- Children with primary liver tumors requiring significant liver resection, or even transplant, are at higher risk of liver injury.
- Children receiving radiation therapy to the liver are at higher risk of liver injury.
- Children undergoing bone marrow transplant are at higher risk of liver injury.

Certain factors, including the type of chemotherapy, the dose and extent of radiation exposure, the influence of surgical interventions, and the evolving impact of viral hepatitis and/or other infectious complication, need additional attention in future studies.

#### Types of hepatobiliary late effects

Asymptomatic elevation of liver enzymes is the most common hepatobiliary complication.

- Asymptomatic elevation of liver enzymes. Liver injury related to treatment for childhood cancer is often asymptomatic and indolent in course. While elevated serum alanine aminotransferase (ALT), aspartate aminotransferase (AST) and gamma glutamyltransferase (GGT) levels can reflect transient acute liver injury during chemotherapy, they are not predictive of late hepatic dysfunction or cirrhosis.
  - Dutch investigators observed hepatobiliary dysfunction in 8.7% of 1,362 long-term survivors (median follow-up, 12.4 years since diagnosis) evaluated by ALT for hepatocellular injury and GGT for biliary tract injury. Cases with a history of viral hepatitis and a history of veno-occlusive disease were excluded.[43]
    - Predictors for elevated ALT and GGT by multivariable analysis included treatment with radiation therapy involving the liver, higher body mass index (BMI), higher alcohol intake, and longer follow-up time; older age at diagnosis was only significantly associated with elevated GGT levels.
  - An SJLIFE study evaluated prevalence of and risk factors for elevated ALT among 2,751 adult survivors of childhood cancer (median age, 31.4 years; median elapsed time from diagnosis, 23.2 years).[44]
    - ALT greater than sex-specific upper limits of normal was prevalent in 41.3% of survivors; however, the prevalence of grade 3 or 4 hepatic injury was infrequent (<1%).
    - Independent risk factors for elevated ALT included non-Hispanic White race and ethnicity, older age at evaluation, being overweight or affected by obesity, presence of metabolic syndrome, current treatment with a statin, hepatitis C infection, previous treatment with busulfan or thioguanine, history of hepatic surgery, and the percentage of liver treated with 10 Gy, 15 Gy, 20 Gy, or higher doses.

Less commonly reported hepatobiliary complications include the following:[45]

##### Cholelithiasis

- In limited studies, an increased risk of cholelithiasis has been linked to ileal conduit, parenteral nutrition, abdominal surgery, abdominal radiation therapy, and HSCT.[46,47]
- The cumulative incidence of late (occurring 5 or more years after cancer diagnosis) cholecystectomy among 25,549 CCSS participants diagnosed between 1970 and 1999 (median follow-up, 21.9 years) was 7.2% compared with 6.6% in a sibling control group (rate ratio, 1.3; 95% CI, 1.1–1.5).[48]
- Independent risk factors for late cholecystectomy include attained age, female sex, increasing BMI, exposure to high-dose (>750 mg/m^2^) platinum chemotherapy (rate ratio, 2.6; 95% CI, 1.5–4.5), vinca alkaloid chemotherapy (rate ratio, 1.4; 95% CI, 1.1–1.8) or TBI (rate ratio, 2.2; 95% CI, 1.2–2.4).[48]

##### Focal nodular hyperplasia

- Lesions made up of regenerating liver called focal nodular hyperplasia (FNH) have been incidentally noted on screening imaging studies after chemotherapy or HSCT.[49,50]
- FNH is thought to represent iatrogenic benign manifestations of vascular damage and have been associated with veno-occlusive disease, high-dose alkylating agents (e.g., busulfan and melphalan), and liver irradiation.[49]
- The prevalence of FNH is unknown; while noted at less than 1% in some papers,[50] this is likely an underestimate.
- In one study of patients who were followed by magnetic resonance imaging (MRI) after transplant to assess liver iron stores, the cumulative incidence of FNH was 35% at 150 months posttransplant.[49]
- FNH can mimic metastatic or subsequent tumors, but MRI imaging has a characteristic pattern and is generally diagnostic.[49]
- Biopsy or resection is usually unnecessary unless the lesions grow or patients have worrisome symptoms.[49]

##### Nodular regenerative hyperplasia

- Nodular regenerative hyperplasia is a rare condition characterized by the development of multiple monoacinar regenerative hepatic nodules and mild fibrosis.[45]
- The pathogenesis of nodular regenerative hyperplasia is not well established but may represent a nonspecific tissue adaptation to heterogeneous hepatic blood flow.[51]
- Nodular regenerative hyperplasia has rarely been observed in survivors of childhood cancer treated with chemotherapy, with or without liver irradiation.[52,53]
- Biopsy may be necessary to distinguish nodular regenerative hyperplasia from a subsequent malignancy.[53]

##### Microvesicular fatty change

- Histological evidence of fatty infiltration (93%) and siderosis (up to 70%) was observed in children with acute lymphoblastic leukemia (ALL) who recently completed intensified therapy. Fibrosis developed in 11% and was associated with higher serum low-density lipoprotein (LDL) cholesterol.[54]
- Fatty liver with insulin resistance has also been reported to develop more frequently in long-term childhood cancer survivors treated with cranial radiation and TBI therapy with allogeneic HSCT without overweight or obesity.[55]
- Prospective studies are needed to define whether acute posttherapy fatty liver change contributes to the development of late steatohepatitis or the metabolic syndrome in this population.

##### Acquired hemochromatosis

- Red blood cell transfusion can result in an accumulation of excess iron caused by the disruption of the homeostasis of iron storage and distribution when exogenous iron is loaded into organs.
- Transfusional iron overload has been reported in pediatric oncology patients, but its prevalence, organ distribution, and severity remain incompletely characterized.
- MRI has emerged as an accurate, noninvasive means for measuring iron in multiple organ systems.[56,57]
- In a cross-sectional study of 103 patients (including 73 no longer receiving therapy), 53% (54 of 102) had moderate or greater hepatic siderosis, 80% (77 of 96) had pancreatic siderosis, 4% (3 of 80) had cardiac siderosis, and 45% (13 of 29) had pituitary siderosis and/or volume loss. Ferritin levels were lower in the patients no longer receiving therapy than in patients receiving therapy (P = .0008). Ferritin was associated with liver iron concentration in only the patients who were no longer receiving therapy (P = .0016). Liver iron concentration and pancreatic iron did not differ between the two groups of patients. Cardiac T2 was slightly lower in patients still receiving therapy, but not at a clinically relevant level.[58]
- Receipt of allogeneic transplant is a significant risk factor for transfusional iron overload.[59]

#### Treatment-related risk factors for hepatobiliary late effects

The type and intensity of previous therapy influences risk for late-occurring hepatobiliary effects. In addition to the risk of treatment-related toxicity, recipients of HSCT frequently experience chronic liver dysfunction related to microvascular, immunologic, infectious, metabolic, and other toxic etiologies.

Key findings related to cancer treatment effect on hepatobiliary complications include the following:

##### Chemotherapy

- Chemotherapeutic agents with established hepatotoxic potential include antimetabolite agents like 6-mercaptopurine, 6-thioguanine, methotrexate, and rarely, dactinomycin.
- Veno-occlusive disease/sinusoidal obstruction syndrome (VOD/SOS) and cholestatic disease have been observed after thiopurine administration, especially 6-thioguanine.[60]
- Progressive fibrosis and portal hypertension have been reported in a subset of children who developed VOD/SOS after treatment with 6-thioguanine.[60]
- Acute, dose-related, reversible VOD/SOS has been observed in children treated with dactinomycin for pediatric solid tumors.[61,62]
- In the transplant setting, VOD/SOS has also been observed after conditioning regimens that have included cyclophosphamide/TBI, busulfan/cyclophosphamide, and carmustine/cyclophosphamide/etoposide.[63] High-dose cyclophosphamide, common to all of these regimens, is speculated to be a potential causative factor.

##### Radiation therapy

- Acute radiation-induced liver disease also causes endothelial cell injury that is characteristic of VOD/SOS.[64]
- In adults, the whole liver has tolerance up to 30 Gy to 35 Gy with conventional fractionation, the prevalence of radiation-induced liver disease varies from 6% to 66% based on the volume of liver involved and on hepatic reserve.[64,65]
- Radiation hepatopathy after contemporary treatment appears to be uncommon in long-term survivors without predisposing conditions, such as viral hepatitis or iron overload.[66]
- The risk of injury in children increases with radiation dose, hepatic volume, younger age at treatment, previous partial hepatectomy, and concomitant use of radiomimetic chemotherapy, such as dactinomycin and doxorubicin.[67-70]
- Survivors who received radiation doses of 40 Gy to at least one-third of the liver volume, doses of 30 Gy or higher to the whole abdomen, or an upper abdominal field involving the entire liver are at highest risk for hepatic dysfunction.[42]
- A PENTEC comprehensive review was performed to develop models to inform dose constraints for radiation-associated hepatic toxicity.[71]
  - In a model developed to calculate the risk of developing SOS after whole-liver radiation therapy, radiation dose and receipt of nonalkylating chemotherapy were significant. Age younger than 20 years at the time of radiation therapy was borderline significant.
  - The predicted risk of SOS was 2% with zero radiation therapy dose, 6.1% after treatment with 10 Gy, and 14.5% after treatment with 20 Gy to the whole liver.
  - Patients with Wilms tumor treated with right flank radiation therapy (estimated dose, 6.54 ± 2.50 Gy) had a higher observed rate of SOS than patients who received left flank radiation therapy (estimated dose, 2.16 ± 1.15 Gy).
  - Data were sparse regarding rates of late liver injury after radiation therapy, which suggests low rates of severe toxicity after treatment for common pediatric malignancies.

##### HSCT

- Chronic liver dysfunction in patients after HSCT is multifactorial in etiology with the most common etiologies including iron overload, chronic GVHD, and viral hepatitis.[72]
- Patients with chronic GVHD of the GI tract who exhibit an elevated bilirubin have a worse prognosis and quality of life.[73]
- While chronic liver dysfunction may be seen in more than one-half of long-term HSCT survivors, and the course of the disease appears to be indolent, continued follow-up is needed to establish its long-term impact on survivor health.[74]

#### Infectious risk factors for hepatobiliary late effects

Viral hepatitis B and C may complicate the treatment course of childhood cancer and result in chronic hepatic dysfunction.

- The incidence of transfusion-related hepatitis C in childhood cancer survivors has ranged from 5% to 50% depending on the geographic location of the reporting center.[75-81]
- Chronic hepatitis predisposes the childhood cancer survivor to cirrhosis, end-stage liver disease, and hepatocellular carcinoma.[79,80]
- Concurrent infection with hepatitis B and C in combination or in co-occurrence with other hepatotrophic viruses accelerates the progression of liver disease.[76,78]
- Because most patients received some type of blood product during childhood cancer treatment and many are unaware of their transfusion history, screening on the basis of date of diagnosis/treatment is recommended.[82]
- All survivors of childhood cancer who received treatment before 1972 should be screened for hepatitis B, and those who received treatment before 1993 should be screened for hepatitis C and referred for discussion of treatment options if screening results are positive.[82]

#### Posttherapy management

Survivors with liver dysfunction should be counseled regarding risk-reduction methods to prevent hepatic injury.

- Standard recommendations include maintenance of a healthy body weight, abstinence from alcohol use, and immunization against hepatitis A and B viruses.[42]
- In patients with chronic hepatitis, precautions to reduce viral transmission to household and sexual contacts should also be reviewed.

Table 7 summarizes hepatobiliary late effects and the related health screenings.

Table 7. Hepatobiliary Late Effects^a^

Predisposing Therapy | Hepatic Effects | Health Screening/Interventions
Methotrexate; mercaptopurine/thioguanine; HSCT | Hepatic dysfunction | Laboratory tests: ALT, AST, bilirubin levels
Methotrexate; mercaptopurine/thioguanine; HSCT | Hepatic dysfunction | Ferritin in those treated with HSCT
Mercaptopurine/thioguanine; HSCT | Veno-occlusive disease/sinusoidal obstructive syndrome | Examination: scleral icterus, jaundice, ascites, hepatomegaly, splenomegaly
Mercaptopurine/thioguanine; HSCT | Veno-occlusive disease/sinusoidal obstructive syndrome | Laboratory tests: ALT, AST, bilirubin, platelet levels
Mercaptopurine/thioguanine; HSCT | Veno-occlusive disease/sinusoidal obstructive syndrome | Ferritin in those treated with HSCT
Radiation exposing liver/biliary tract; HSCT | Hepatic fibrosis/cirrhosis; focal nodular hyperplasia | Examination: jaundice, spider angiomas, palmar erythema, xanthomata, hepatomegaly, splenomegaly
Radiation exposing liver/biliary tract; HSCT | Hepatic fibrosis/cirrhosis; focal nodular hyperplasia | Laboratory tests: ALT, AST, bilirubin levels
Radiation exposing liver/biliary tract; HSCT | Hepatic fibrosis/cirrhosis; focal nodular hyperplasia | Ferritin in those treated with HSCT
Radiation exposing liver/biliary tract; HSCT | Hepatic fibrosis/cirrhosis; focal nodular hyperplasia | Prothrombin time for evaluation of hepatic synthetic function in patients with abnormal liver screening tests
Radiation exposing liver/biliary tract; HSCT | Hepatic fibrosis/cirrhosis; focal nodular hyperplasia | Screen for viral hepatitis in patients with persistently abnormal liver function or any patient transfused before 1993
Radiation exposing liver/biliary tract; HSCT | Hepatic fibrosis/cirrhosis; focal nodular hyperplasia | Gastroenterology/hepatology consultation in patients with persistent liver dysfunction
Radiation exposing liver/biliary tract; HSCT | Hepatic fibrosis/cirrhosis; focal nodular hyperplasia | Hepatitis A and B immunizations in patients lacking immunity
Radiation exposing liver/biliary tract; HSCT | Hepatic fibrosis/cirrhosis; focal nodular hyperplasia | Consider phlebotomy and chelation therapy for iron overload
Radiation exposing liver/biliary tract | Cholelithiasis | History: colicky abdominal pain related to fatty food intake, excessive flatulence
Radiation exposing liver/biliary tract | Cholelithiasis | Examination: right upper quadrant or epigastric tenderness (acute episode)
Radiation exposing liver/biliary tract | Cholelithiasis | Consider gallbladder ultrasonography in patients with chronic abdominal pain

ALT = alanine aminotransferase; AST = aspartate aminotransferase; HSCT = hematopoietic stem cell transplant.

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### Pancreas

The pancreas has been thought to be relatively radioresistant because of a paucity of information about late pancreatic-related effects. However, children and young adults treated with TBI or abdominal irradiation are known to have an increased risk of insulin resistance and diabetes mellitus.[83-85]

While corticosteroids and asparaginase are associated with acute toxicity to the pancreas, late sequelae in the form of exocrine or endocrine pancreatic function for those who sustain acute injury have not been reported.

Evidence (risk of diabetes mellitus):

1. The prevalence of prediabetes among survivors of childhood cancer, risk factors for progression to diabetes, and association between prediabetes and late cardiovascular events and chronic kidney disease were investigated using the SJLIFE cohort.[86]
  - The prevalence of prediabetes (defined as fasting plasma glucose level of 100–125 mg/dL or hemoglobin A1c of 5.7%–6.4%) was assessed in 3,529 adult survivors of childhood cancer. The prevalence of prediabetes in survivors (median age, 30 years) was 29.2%, and the prevalence of diabetes was 6.5%.
  - By age 40 to 49 years, the prevalence of prediabetes was 45.5%, and in each age strata, survivors had a significantly higher prevalence of prediabetes and diabetes than controls (P < .0025). Among the 695 survivors with prediabetes who underwent longitudinal follow-up, 10% progressed to diabetes.
  - Radiation exposure to the pancreatic tail was the only treatment that significantly increased the risk of prediabetes, independent of age, sex, race, BMI, physical activity, and other therapy exposures.
  - Compared with survivors with normal glucose control, adjusting for relevant treatment exposures, survivors with prediabetes were at an increased risk of future myocardial infarction (hazard ratio [HR], 2.4) and chronic kidney disease (HR, 2.9), while survivors with diabetes were also at an increased risk of future cardiomyopathy (HR, 3.8) and stroke (HR, 3.4).
2. CCSS investigators evaluated the risk of diabetes mellitus among 20,762 5-year childhood cancer survivors and 4,853 siblings.[87]
  - Survivors exposed to abdominal radiation (n = 4,568) were almost three times more likely to develop diabetes than were siblings and 1.6 times more likely than survivors who were not exposed to abdominal radiation.
  - Among survivors treated with abdominal radiation therapy, multivariable modeling identified independent risk factors for developing diabetes, which included older attained age, higher BMI, and increasing dose to the pancreatic tail.
  - A significant interaction was also identified between younger age (<10 years) at cancer diagnosis and higher mean pancreatic tail dose.
3. SJLIFE study investigators evaluated the prevalence of and risk factors for diabetes mellitus among 1,044 adult survivors of childhood ALL (mean age, 34 years) who were clinically assessed more than 10 years after treatment and 368 community controls (mean age, 35 years).[88]
  - Type 2 diabetes mellitus was prevalent in 7.5% of survivors and 3.8% of controls.
  - Independent risk factors for developing diabetes among survivors included older age (OR, 1.05 for each additional year), BMI of 30 kg/m^2^ or higher (OR, 7.4), and history of drug-induced hyperglycemia during therapy (OR, 4.67).
4. A retrospective cohort study, based on self-reports of 2,520 5-year survivors of childhood cancer treated in France and the United Kingdom, investigated the relationship between radiation dose to the pancreas and risk of a subsequent diabetes mellitus diagnosis.[89]
  - Sixty-five cases of diabetes mellitus were validated; the risk increased with radiation therapy to the tail of the pancreas, where the islets of Langerhans are concentrated. Risk increased up to 20 to 29 Gy and then plateaued. The estimated RR at 1 Gy was 1.61.
  - Radiation dose to other parts of the pancreas did not have a significant effect.
  - Compared with patients who did not receive radiation therapy, the RR of diabetes mellitus was 11.5 in patients who received more than 10 Gy to the pancreas.
  - Children younger than 2 years at the time of radiation therapy were more sensitive than were older patients (RR at 1 Gy was 2.1 for the young age group vs. 1.4 for older patients).
  - For the 511 patients who received more than 10 Gy, the cumulative incidence of diabetes mellitus was 16%.
5. Another study evaluated the risk of diabetes mellitus in 2,264 5-year survivors of Hodgkin lymphoma (42% younger than 25 years at diagnosis) after a median follow-up of 21.5 years.[90]
  - The cumulative incidence of diabetes mellitus was 8.3% (95% CI, 6.9%–9.8%) for the overall cohort and 14.2% (95% CI, 10.7%–18.3%) for those treated with more than 36 Gy para-aortic radiation.
  - Survivors treated with more than 36 Gy of radiation to the para-aortic lymph nodes and spleen had a 2.3-fold increased risk of diabetes mellitus compared with those who did not receive radiation therapy.
  - The risk of diabetes mellitus increased with higher doses to the pancreatic tail.

For digestive system late effects information, including risk factors, evaluation, and health counseling, see the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### References

Hölttä P, Alaluusua S, Saarinen-Pihkala UM, et al.: Agenesis and microdontia of permanent teeth as late adverse effects after stem cell transplantation in young children. Cancer 103 (1): 181-90, 2005.15540242
Hölttä P, Hovi L, Saarinen-Pihkala UM, et al.: Disturbed root development of permanent teeth after pediatric stem cell transplantation. Dental root development after SCT. Cancer 103 (7): 1484-93, 2005.15739206
Kaste SC, Goodman P, Leisenring W, et al.: Impact of radiation and chemotherapy on risk of dental abnormalities: a report from the Childhood Cancer Survivor Study. Cancer 115 (24): 5817-27, 2009.19834960
Paulino AC, Simon JH, Zhen W, et al.: Long-term effects in children treated with radiotherapy for head and neck rhabdomyosarcoma. Int J Radiat Oncol Biol Phys 48 (5): 1489-95, 2000.11121653 20573313
Maciel JC, de Castro CG, Brunetto AL, et al.: Oral health and dental anomalies in patients treated for leukemia in childhood and adolescence. Pediatr Blood Cancer 53 (3): 361-5, 2009.19484760
Hsieh SG, Hibbert S, Shaw P, et al.: Association of cyclophosphamide use with dental developmental defects and salivary gland dysfunction in recipients of childhood antineoplastic therapy. Cancer 117 (10): 2219-27, 2011.21523736
Dahllöf G: Oral and dental late effects after pediatric stem cell transplantation. Biol Blood Marrow Transplant 14 (1 Suppl 1): 81-3, 2008.18162225
Hölttä P, Alaluusua S, Saarinen-Pihkala UM, et al.: Long-term adverse effects on dentition in children with poor-risk neuroblastoma treated with high-dose chemotherapy and autologous stem cell transplantation with or without total body irradiation. Bone Marrow Transplant 29 (2): 121-7, 2002.11850706 21838029
Effinger KE, Migliorati CA, Hudson MM, et al.: Oral and dental late effects in survivors of childhood cancer: a Children's Oncology Group report. Support Care Cancer 22 (7): 2009-19, 2014.24781353
Kang CM, Hahn SM, Kim HS, et al.: Clinical Risk Factors Influencing Dental Developmental Disturbances in Childhood Cancer Survivors. Cancer Res Treat 50 (3): 926-935, 2018.29020731
Çetiner D, Çetiner S, Uraz A, et al.: Oral and dental alterations and growth disruption following chemotherapy in long-term survivors of childhood malignancies. Support Care Cancer 27 (5): 1891-1899, 2019.30203360
Patni T, Lee CT, Li Y, et al.: Factors for poor oral health in long-term childhood cancer survivors. BMC Oral Health 23 (1): 73, 2023.36739372
Thompson RF, Schneider RA, Albertini F, et al.: Dose to the developing dentition during therapeutic irradiation: organ at risk determination and clinical implications. Int J Radiat Oncol Biol Phys 86 (1): 108-13, 2013.23332385
Maguire A, Craft AW, Evans RG, et al.: The long-term effects of treatment on the dental condition of children surviving malignant disease. Cancer 60 (10): 2570-5, 1987.3664436 88026645
Paulino AC: Role of radiation therapy in parameningeal rhabdomyosarcoma. Cancer Invest 17 (3): 223-30, 1999.10099663 99199412
Kaste SC, Hopkins KP, Jones D, et al.: Dental abnormalities in children treated for acute lymphoblastic leukemia. Leukemia 11 (6): 792-6, 1997.9177429 97320578
Elzembely MM, Dahlberg AE, Pinto N, et al.: Late effects in high-risk neuroblastoma survivors treated with high-dose chemotherapy and stem cell rescue. Pediatr Blood Cancer 66 (1): e27421, 2019.30151986
Jensen SB, Pedersen AM, Vissink A, et al.: A systematic review of salivary gland hypofunction and xerostomia induced by cancer therapies: prevalence, severity and impact on quality of life. Support Care Cancer 18 (8): 1039-60, 2010.20237805
Jensen SB, Pedersen AM, Vissink A, et al.: A systematic review of salivary gland hypofunction and xerostomia induced by cancer therapies: management strategies and economic impact. Support Care Cancer 18 (8): 1061-79, 2010.20333412
Garming Legert K, Remberger M, Ringdèn O, et al.: Salivary secretion in children after fractionated or single-dose TBI. Bone Marrow Transplant 47 (3): 404-10, 2012.21552301
Bölling T, Weege J, Eich HT, et al.: Acute and late side effects to salivary glands and oral mucosa after head and neck radiotherapy in children and adolescents. Results of the "Registry for the evaluation of side effects after radiotherapy in childhood and adolescence". Head Neck 37 (8): 1137-41, 2015.24764129
Milgrom SA, van Luijk P, Pino R, et al.: Salivary and Dental Complications in Childhood Cancer Survivors Treated With Radiation Therapy to the Head and Neck: A PENTEC Comprehensive Review. Int J Radiat Oncol Biol Phys 119 (2): 467-481, 2024.34074567
Dahllöf G, Wondimu B, Barr-Agholme M, et al.: Xerostomia in children and adolescents after stem cell transplantation conditioned with total body irradiation or busulfan. Oral Oncol 47 (9): 915-9, 2011.21784697
Garming-Legert K, Remberger M, Ringdén O, et al.: Long-term salivary function after conditioning with busulfan, fractionated or single-dose TBI. Oral Dis 17 (7): 670-6, 2011.21718391
Gevorgyan A, La Scala GC, Neligan PC, et al.: Radiation-induced craniofacial bone growth disturbances. J Craniofac Surg 18 (5): 1001-7, 2007.17912072
Sulaiman F, Huryn JM, Zlotolow IM: Dental extractions in the irradiated head and neck patient: a retrospective analysis of Memorial Sloan-Kettering Cancer Center protocols, criteria, and end results. J Oral Maxillofac Surg 61 (10): 1123-31, 2003.14586845
Vissink A, Jansma J, Spijkervet FK, et al.: Oral sequelae of head and neck radiotherapy. Crit Rev Oral Biol Med 14 (3): 199-212, 2003.12799323
Hong CH, Napeñas JJ, Hodgson BD, et al.: A systematic review of dental disease in patients undergoing cancer therapy. Support Care Cancer 18 (8): 1007-21, 2010.20449756
Goldsby R, Chen Y, Raber S, et al.: Survivors of childhood cancer have increased risk of gastrointestinal complications later in life. Gastroenterology 140 (5): 1464-71.e1, 2011.21315721
Bölling T, Willich N, Ernst I: Late effects of abdominal irradiation in children: a review of the literature. Anticancer Res 30 (1): 227-31, 2010.20150640
Churnratanakul S, Wirzba B, Lam T, et al.: Radiation and the small intestine. Future perspectives for preventive therapy. Dig Dis 8 (1): 45-60, 1990.2406051 90150641
Sher ME, Bauer J: Radiation-induced enteropathy. Am J Gastroenterol 85 (2): 121-8, 1990.2301333 90144638
Emami B, Lyman J, Brown A, et al.: Tolerance of normal tissue to therapeutic irradiation. Int J Radiat Oncol Biol Phys 21 (1): 109-22, 1991.2032882 91236476
Weil BR, Murphy AJ, Liu Q, et al.: Late Health Outcomes Among Survivors of Wilms Tumor Diagnosed Over Three Decades: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 41 (14): 2638-2650, 2023.36693221
Madenci AL, Fisher S, Diller LR, et al.: Intestinal Obstruction in Survivors of Childhood Cancer: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 33 (26): 2893-900, 2015.26261256
Madenci AL, Dieffenbach BV, Liu Q, et al.: Late-onset anorectal disease and psychosocial impact in survivors of childhood cancer: A report from the Childhood Cancer Survivor Study. Cancer 125 (21): 3873-3881, 2019.31322729
Heyn R, Raney RB, Hays DM, et al.: Late effects of therapy in patients with paratesticular rhabdomyosarcoma. Intergroup Rhabdomyosarcoma Study Committee. J Clin Oncol 10 (4): 614-23, 1992.1548524 92193972
Hughes LL, Baruzzi MJ, Ribeiro RC, et al.: Paratesticular rhabdomyosarcoma: delayed effects of multimodality therapy and implications for current management. Cancer 73 (2): 476-82, 1994.8293416
Raney B, Heyn R, Hays DM, et al.: Sequelae of treatment in 109 patients followed for 5 to 15 years after diagnosis of sarcoma of the bladder and prostate. A report from the Intergroup Rhabdomyosarcoma Study Committee. Cancer 71 (7): 2387-94, 1993.8453560
Asdahl PH, Oeffinger KC, Albieri V, et al.: Esophageal disease among childhood cancer survivors-A report from the Childhood Cancer Survivors Study. Pediatr Blood Cancer 68 (8): e29043, 2021.33844445
Mulder RL, van Dalen EC, Van den Hof M, et al.: Hepatic late adverse effects after antineoplastic treatment for childhood cancer. Cochrane Database Syst Rev (7): CD008205, 2011.21735424
Castellino S, Muir A, Shah A, et al.: Hepato-biliary late effects in survivors of childhood and adolescent cancer: a report from the Children's Oncology Group. Pediatr Blood Cancer 54 (5): 663-9, 2010.19890896
Mulder RL, Kremer LC, Koot BG, et al.: Surveillance of hepatic late adverse effects in a large cohort of long-term survivors of childhood cancer: prevalence and risk factors. Eur J Cancer 49 (1): 185-93, 2013.22901831
Green DM, Wang M, Krasin MJ, et al.: Serum Alanine Aminotransferase Elevations in Survivors of Childhood Cancer: A Report From the St. Jude Lifetime Cohort Study. Hepatology 69 (1): 94-106, 2019.30016547
Castellino SM, Hudson MM: Late gastrointestinal and hepatic effects. In: Schwartz CL, Hobbie WL, Constine LS, et al., eds.: Survivors of Childhood and Adolescent Cancer: A Multidisciplinary Approach. 3rd ed. Springer International Publishing, 2015, pp 229-52.
Mahmoud H, Schell M, Pui CH: Cholelithiasis after treatment for childhood cancer. Cancer 67 (5): 1439-42, 1991.1899356
Safford SD, Safford KM, Martin P, et al.: Management of cholelithiasis in pediatric patients who undergo bone marrow transplantation. J Pediatr Surg 36 (1): 86-90, 2001.11150443
Dieffenbach BV, Li N, Madenci AL, et al.: Incidence of and risk factors for late cholecystectomy in survivors of childhood cancer: A report from the Childhood Cancer Survivor Study. Eur J Cancer 133: 4-13, 2020.32422507
Sudour H, Mainard L, Baumann C, et al.: Focal nodular hyperplasia of the liver following hematopoietic SCT. Bone Marrow Transplant 43 (2): 127-32, 2009.18806834
Lee MH, Yoo SY, Kim JH, et al.: Hypervascular hepatic nodules in childhood cancer survivors: clinical and imaging features. Clin Imaging 36 (4): 301-7, 2012 Jul-Aug.22726968
Wanless IR: Micronodular transformation (nodular regenerative hyperplasia) of the liver: a report of 64 cases among 2,500 autopsies and a new classification of benign hepatocellular nodules. Hepatology 11 (5): 787-97, 1990.2189821
Brisse H, Servois V, Bouche B, et al.: Hepatic regenerating nodules: a mimic of recurrent cancer in children. Pediatr Radiol 30 (6): 386-93, 2000.10876822
Chu WC, Roebuck DJ: Nodular regenerative hyperplasia of the liver simulating metastases following treatment for bilateral Wilms tumor. Med Pediatr Oncol 41 (1): 85-7, 2003.12764757
Halonen P, Mattila J, Ruuska T, et al.: Liver histology after current intensified therapy for childhood acute lymphoblastic leukemia: microvesicular fatty change and siderosis are the main findings. Med Pediatr Oncol 40 (3): 148-54, 2003.12518342
Tomita Y, Ishiguro H, Yasuda Y, et al.: High incidence of fatty liver and insulin resistance in long-term adult survivors of childhood SCT. Bone Marrow Transplant 46 (3): 416-25, 2011.20562924
Ruccione KS, Wood JC, Sposto R, et al.: Characterization of transfusion-derived iron deposition in childhood cancer survivors. Cancer Epidemiol Biomarkers Prev 23 (9): 1913-9, 2014.24962841
Vag T, Kentouche K, Krumbein I, et al.: Noninvasive measurement of liver iron concentration at MRI in children with acute leukemia: initial results. Pediatr Radiol 41 (8): 980-4, 2011.21674286
Baskin-Miller J, Carson S, Jaffray J, et al.: Transfusional hemosiderosis in childhood cancer patients and survivors. Pediatr Blood Cancer 71 (10): e31220, 2024.39096194
Schempp A, Lee J, Kearney S, et al.: Iron Overload in Survivors of Childhood Cancer. J Pediatr Hematol Oncol 38 (1): 27-31, 2016.26422286
Broxson EH, Dole M, Wong R, et al.: Portal hypertension develops in a subset of children with standard risk acute lymphoblastic leukemia treated with oral 6-thioguanine during maintenance therapy. Pediatr Blood Cancer 44 (3): 226-31, 2005.15503293
Green DM, Norkool P, Breslow NE, et al.: Severe hepatic toxicity after treatment with vincristine and dactinomycin using single-dose or divided-dose schedules: a report from the National Wilms' Tumor Study. J Clin Oncol 8 (9): 1525-30, 1990.2167951 90362168
Sulis ML, Bessmertny O, Granowetter L, et al.: Veno-occlusive disease in pediatric patients receiving actinomycin D and vincristine only for the treatment of rhabdomyosarcoma. J Pediatr Hematol Oncol 26 (12): 843-6, 2004.15591910
McDonald GB: Hepatobiliary complications of hematopoietic cell transplantation, 40 years on. Hepatology 51 (4): 1450-60, 2010.20373370
Dawson LA, Ten Haken RK: Partial volume tolerance of the liver to radiation. Semin Radiat Oncol 15 (4): 279-83, 2005.16183482
Milano MT, Constine LS, Okunieff P: Normal tissue tolerance dose metrics for radiation therapy of major organs. Semin Radiat Oncol 17 (2): 131-40, 2007.17395043
Pan CC, Kavanagh BD, Dawson LA, et al.: Radiation-associated liver injury. Int J Radiat Oncol Biol Phys 76 (3 Suppl): S94-100, 2010.20171524
Bhanot P, Cushing B, Philippart A, et al.: Hepatic irradiation and adriamycin cardiotoxicity. J Pediatr 95 (4): 561-3, 1979.225461
Flentje M, Weirich A, Pötter R, et al.: Hepatotoxicity in irradiated nephroblastoma patients during postoperative treatment according to SIOP9/GPOH. Radiother Oncol 31 (3): 222-8, 1994.8066205
Kun LE, Camitta BM: Hepatopathy following irradiation and adriamycin. Cancer 42 (1): 81-4, 1978.667811
Tefft M: Radiation related toxicities in National Wilms' Tumor Study Number 1. Int J Radiat Oncol Biol Phys 2 (5-6): 455-63, 1977 May-Jun.195920
Hall MD, Howell RM, Jackson A, et al.: Liver Late Effects in Childhood Cancer Survivors Treated With Radiation Therapy: A PENTEC Comprehensive Review. Int J Radiat Oncol Biol Phys 119 (2): 575-587, 2024.37480885
Levitsky J, Sorrell MF: Hepatic complications of hematopoietic cell transplantation. Curr Gastroenterol Rep 9 (1): 60-5, 2007.17335679
Pidala J, Chai X, Kurland BF, et al.: Analysis of gastrointestinal and hepatic chronic graft-versus-host [corrected] disease manifestations on major outcomes: a chronic graft-versus-host [corrected] disease consortium study. Biol Blood Marrow Transplant 19 (5): 784-91, 2013.23395601
Tomás JF, Pinilla I, García-Buey ML, et al.: Long-term liver dysfunction after allogeneic bone marrow transplantation: clinical features and course in 61 patients. Bone Marrow Transplant 26 (6): 649-55, 2000.11035372
Aricò M, Maggiore G, Silini E, et al.: Hepatitis C virus infection in children treated for acute lymphoblastic leukemia. Blood 84 (9): 2919-22, 1994.7949165 95036326
Castellino S, Lensing S, Riely C, et al.: The epidemiology of chronic hepatitis C infection in survivors of childhood cancer: an update of the St Jude Children's Research Hospital hepatitis C seropositive cohort. Blood 103 (7): 2460-6, 2004.14684419
Cesaro S, Petris MG, Rossetti F, et al.: Chronic hepatitis C virus infection after treatment for pediatric malignancy. Blood 90 (3): 1315-20, 1997.9242567
Fink FM, Höcker-Schulz S, Mor W, et al.: Association of hepatitis C virus infection with chronic liver disease in paediatric cancer patients. Eur J Pediatr 152 (6): 490-2, 1993.7687544
Locasciulli A, Testa M, Pontisso P, et al.: Hepatitis C virus genotypes and liver disease in patients undergoing allogeneic bone marrow transplantation. Bone Marrow Transplant 19 (3): 237-40, 1997.9028552
Locasciulli A, Testa M, Pontisso P, et al.: Prevalence and natural history of hepatitis C infection in patients cured of childhood leukemia. Blood 90 (11): 4628-33, 1997.9373275 98043653
Paul IM, Sanders J, Ruggiero F, et al.: Chronic hepatitis C virus infections in leukemia survivors: prevalence, viral load, and severity of liver disease. Blood 93 (11): 3672-7, 1999.10339473
Lansdale M, Castellino S, Marina N, et al.: Knowledge of hepatitis C virus screening in long-term pediatric cancer survivors: a report from the Childhood Cancer Survivor Study. Cancer 116 (4): 974-82, 2010.20041485
van Waas M, Neggers SJ, Raat H, et al.: Abdominal radiotherapy: a major determinant of metabolic syndrome in nephroblastoma and neuroblastoma survivors. PLoS One 7 (12): e52237, 2012.23251703
Neville KA, Cohn RJ, Steinbeck KS, et al.: Hyperinsulinemia, impaired glucose tolerance, and diabetes mellitus in survivors of childhood cancer: prevalence and risk factors. J Clin Endocrinol Metab 91 (11): 4401-7, 2006.16954158
Baker KS, Ness KK, Steinberger J, et al.: Diabetes, hypertension, and cardiovascular events in survivors of hematopoietic cell transplantation: a report from the bone marrow transplantation survivor study. Blood 109 (4): 1765-72, 2007.17047152
Dixon SB, Wang F, Lu L, et al.: Prediabetes and Associated Risk of Cardiovascular Events and Chronic Kidney Disease Among Adult Survivors of Childhood Cancer in the St Jude Lifetime Cohort. J Clin Oncol 42 (9): 1031-1043, 2024.38091552
Friedman DN, Moskowitz CS, Hilden P, et al.: Radiation Dose and Volume to the Pancreas and Subsequent Risk of Diabetes Mellitus: A Report from the Childhood Cancer Survivor Study. J Natl Cancer Inst 112 (5): 525-532, 2020.31329225
Williams HE, Howell CR, Chemaitilly W, et al.: Diabetes mellitus among adult survivors of childhood acute lymphoblastic leukemia: A report from the St. Jude Lifetime Cohort Study. Cancer 126 (4): 870-878, 2020.31714590
de Vathaire F, El-Fayech C, Ben Ayed FF, et al.: Radiation dose to the pancreas and risk of diabetes mellitus in childhood cancer survivors: a retrospective cohort study. Lancet Oncol 13 (10): 1002-10, 2012.22921663
van Nimwegen FA, Schaapveld M, Janus CP, et al.: Risk of diabetes mellitus in long-term survivors of Hodgkin lymphoma. J Clin Oncol 32 (29): 3257-63, 2014.25154821

## Late Effects of the Endocrine System

Endocrine dysfunction is common among survivors of childhood cancer, especially in those who were treated with surgery or radiation therapy that involved hormone-producing organs and those who received alkylating agent chemotherapy.

Figure 6. Prevalence of endocrine disorders at the last follow-up visit, by sex. Brignardello E, Felicetti F, Castiglione A, et al.: Endocrine health conditions in adult survivors of childhood cancer: the need for specialized adult-focused follow-up clinics. European Journal of Endocrinology 168 (3): 465-472, 2013. Copyright © 2013, European Society of Endocrinology.

Chart showing the prevalence of endocrine disorders at the last follow-up visit by gender.

The prevalence of specific endocrine disorders is affected by the following:[1-4]

- Patient factors (e.g., age at treatment and sex).
- Tumor location (e.g., suprasellar and nonsuprasellar).[5]
- Treatment factors (e.g., radiation dose and treatment volume).
- Time from radiation exposure (typically increases with longer time from radiation exposure [see Figure 6]).[1]

Endocrinologic late effects can be broadly categorized as those resulting from hypothalamic-pituitary injury or from peripheral glandular compromise.[1-4] The former are most common after treatment for central nervous system (CNS) tumors. The prevalence of these late effects was 24.8% in a nationwide cohort study of 718 survivors who lived longer than 2 years and all hypothalamic-pituitary axes were affected.[3]

The following sections summarize research that characterizes the clinical features of survivors at risk of endocrine dysfunction that impacts pituitary, thyroid, adrenal, and gonadal function.

### Thyroid Gland

- Thyroid dysfunction is a common delayed effect after radiation therapy exposures to fields that include the thyroid gland. This type of radiation therapy is used in treating Hodgkin lymphoma, brain tumors, head and neck sarcomas, and acute lymphoblastic leukemia (ALL).
- There is considerable evidence linking radiation exposure to thyroid abnormalities. However, the prevalence of specific conditions varies widely because studies are limited by cohort selection and participation bias, heterogeneity in radiation treatment approach, time since radiation exposure, and method of ascertainment (e.g., self-report vs. clinical or diagnostic imaging assessment).
- Thyroid abnormalities observed in excess in childhood cancer survivors include the following:
  - Primary hypothyroidism.
  - Hyperthyroidism.
  - Goiter.
  - Nodules.

#### Hypothyroidism

##### Risk factors

Thyroid radiation therapy. An increased risk of hypothyroidism has been reported among childhood cancer survivors treated with head and neck radiation exposing the thyroid gland, especially among survivors of Hodgkin lymphoma.[1-4] Among survivors of head and neck tumors treated with radiation therapy potentially exposing the hypothalamic-pituitary region and the thyroid gland, hypothyroidism may result from thyrotropin-releasing hormone (TRH) and/or thyroid-stimulating hormone (TSH) deficiency (central hypothyroidism), thyroid gland dysfunction (primary hypothyroidism), or a combination of central and primary causes.

Iodine I 131-metaiodobenzylguanidine (131I-MIBG).

- Therapeutic 131I-MIBG. Thyroid disorders, including primary hypothyroidism, have been reported in children with neuroblastoma who were treated with 131I-MIBG, despite thyroid protection with potassium iodide, perchlorate, or the combination of potassium iodide, thyroxine (T_4_), and a thiamazole. However, these reports feature small numbers of patients who have other treatment-related risk factors for thyroid disorders, which limits the ability to identify an independent effect of 131I-MIBG.[6] Thyroid disorders were diagnosed in 81% of survivors 15 years after treatment with 131I-MIBG.[7]
- Diagnostic 131I-MIBG. Late-onset thyroid abnormalities have not been reported among childhood cancer survivors who had either 131I-MIBG or 123I-MIBG to monitor disease status.[8,9]
  - A retrospective cohort study (n = 48) assessed the prevalence of thyroid dysfunction in survivors of a neuroblastic tumor who received 123I-MIBG for diagnostic purposes. All patients received thyroid prophylaxis (potassium iodide or combination of potassium iodide, thiamazole, and T_4_) during exposure to 123I-MIBG. After a median follow up of 6.6 years, thyroid function was normal in 46 of the 48 survivors. Two survivors had mild thyroid dysfunction.[10]

Thyroidectomy. As observed in the general, noncancer population, partial or obviously subtotal surgical resection of the thyroid is a risk factor for subsequent hypothyroidism.[11-13]

Evidence (prevalence of and risk factors for hypothyroidism):

1. The German Group of Paediatric Radiation Oncology reported on 1,086 patients treated at 62 centers, including 404 patients (median age, 10.9 years) who received radiation therapy to the thyroid and/or pituitary gland.[14] Follow-up information was available for 264 patients (60.9%; median follow-up, 40 months), with 60 patients (22.7%) showing pathological values.
  - Compared with patients treated with prophylactic cranial irradiation (median dose, 12 Gy), the hazard ratio (HR) for the development of pathological thyroid blood values was 3.072 (P = .002) for patients treated with radiation doses of 15 Gy to 25 Gy to the thyroid gland.
  - The HR was 3.769 (P = .009) for patients treated with more than 25 Gy of radiation to the thyroid gland. The HR was 5.674 (P < .001) for patients treated with craniospinal irradiation (CSI).
  - The cumulative incidence of thyroid hormone substitution therapy did not differ between defined subgroups.
2. The Childhood Cancer Survivor Study (CCSS) investigated the prevalence of self-reported hypothyroidism assessed through serial questionnaires in 12,015 survivors. A total of 1,193 cases of hypothyroidism were observed, 777 (65%) of which occurred 5 or more years after a cancer diagnosis.[15]
  - The prevalence at 5 years after a cancer diagnosis and the incidence through 30 years after a cancer diagnosis was the highest in 5-year survivors of Hodgkin lymphoma (32.3%) and CNS tumors (17.7%).
  - The incidence was significantly associated with radiation dose to the thyroid and pituitary. The combined effects of thyroid and hypothalamic-pituitary doses appear to be less than additive when pituitary doses are greater than 16 Gy.
  - Radiation-related risks were higher in males than females and inversely associated with age at exposure and time since exposure but remained elevated more than 25 years after exposure.
  - Certain types of chemotherapy were significantly associated with the risk: bleomycin (rate ratio, 3.4), and the alkylating agents lomustine (rate ratio, 3.0) and cyclophosphamide (rate ratio, 1.3). The strongest chemotherapy-associated risk occurred among survivors of CNS cancer. A significant dose response for lomustine was observed (P < .01).
3. In the CCSS, a cohort of childhood Hodgkin lymphoma survivors treated between 1970 and 1986 were evaluated for thyroid disease by use of a self-report questionnaire.[16]
  - Among 1,791 survivors who were followed for a median of 14 years, 34% reported that they had been diagnosed with at least one thyroid abnormality.
  - For hypothyroidism, there was a clear dose response, with a 20-year risk of:
    - 20% for those who received less than 35 Gy of radiation to the thyroid gland.
    - 30% for those who received 35 Gy to 44.9 Gy of radiation to the thyroid gland.
    - 50% for those who received more than 45 Gy of radiation to the thyroid gland.
  - Compared with a sibling control group, the relative risk (RR) was 17.1 for hypothyroidism.
  - Elapsed time since diagnosis was a risk factor for hypothyroidism, with the risk increasing in the first 3 to 5 years postdiagnosis.
  - Females were at increased risk for hypothyroidism.
4. A follow-up study from the CCSS compared self-reported data from 14,290 survivors with data from 4,031 sibling controls.[2]
  - The RR was 3.8 for hypothyroidism and remained significantly higher in survivors when compared with controls, even in the absence of radiation therapy to the thyroid or pituitary.
  - These results indicate the need for continued and individualized long-term monitoring strategies in childhood cancer survivors.
5. Continuous improvements in the precision of radiation therapy delivery carry the promise to decrease the radiation therapy dose received by the thyroid in a subset of patients. This was demonstrated in a study of 189 children and young adults (aged <26 years) with brain tumors treated with proton radiation therapy.[17]
  - At a median follow-up of 4.4 years, the cumulative incidence of primary hypothyroidism was 3% after CSI and 1.6% overall, which is substantially lower than previous reports of 56% to 65% incidence after CSI with photons.
6. Among 118 survivors of medulloblastoma (median follow-up, 5.6 years), the estimated cumulative incidence of hypothyroidism was 35.8% (95% confidence interval [CI], 26.7%–47.1%) by 5 years after radiation therapy.[18]
  - The median time from the end of radiation therapy to the development of hypothyroidism was 2.1 years (range, 0.1–7.1 years) after proton radiation therapy and 2.9 years (range, 0.8–7.2 years) after photon radiation therapy.
  - The rate of hypothyroidism (HR, 2.36; 95% CI, 1.11–5.02) was higher among patients treated with photon radiation therapy compared with those treated with proton radiation therapy.
  - Differences in hypothyroidism risk by radiation modality were largely attributed to higher rates of primary hypothyroidism after photon radiation therapy (HR, 4.61; 95% CI, 1.20–17.66).
7. St. Jude Life (SJLIFE) cohort study investigators evaluated the prevalence of and risk factors for primary hypothyroidism and its associations with chronic health conditions and quality of life among 2,965 childhood cancer survivors (median age, 30.9 years; median time postdiagnosis, 22.3 years).[13]
  - Primary hypothyroidism was prevalent in 14.7% of survivors. It was more common in females (odds ratio [OR], 1.06; 95% CI, 1.03–1.08) and survivors diagnosed older than 15 years (vs. age <5 years). It was less common in non-White survivors (OR, 0.96; 95% CI, 0.93–0.99).
  - Radiation therapy potentially exposing the thyroid gland was associated with dose-related risk of hypothyroidism.
  - Significant associations with primary hypothyroidism included frailty (OR, 1.54; 95% CI, 1.05–2.26), dyslipidemia (OR, 1.52; 95% CI, 1.14–2.04), and impaired physical quality of life (OR, 1.66; 95% CI, 1.12–2.48).
8. The Pediatric Normal Tissue Effects in the Clinic (PENTEC) research consortium performed a systematic review of radiation-associated primary hypothyroidism in children younger than 21 years between 1970 and 2017.[19]
  - At mean doses of 10 Gy, 20 Gy, and 30 Gy, predicted rates of uncompensated (clinical) hypothyroidism were 4%, 7%, and 13%, respectively. The compensated (subclinical) hypothyroidism rates were 12%, 25% and 44%, respectively.
  - Female sex (RR, 1.7; P < .0001) and age younger than 15 years at the time of radiation therapy (RR, 1.3; P < .005) were associated with higher risks of hypothyroidism.
  - After a mean thyroid dose of 20 Gy, predicted rates of hypothyroidism were 13% for males younger than 14 years and more than 29% for females older than 15 years at the time of radiation therapy.
  Table 8. Risks of Hypothyroidism (Compensated or Uncompensated) After Radiation Therapy for Pediatric Malignancies, Grouped by Mean Thyroid Dose, Age, and Sex^a^
  Mean Thyroid Dose | Risk of Hypothyroidism^b^
  Mean Thyroid Dose | Age <14 y^c^ | | Age >15 y^c^
  Mean Thyroid Dose | Female | Male | Female | Male
  10 Gy | 10% | 6% | 14% | 8%
  20 Gy | 22% | 13% | 29% | 17%
  30 Gy | 39% | 23% | 53% | 31%
  40 Gy | 59% | 35% | 79% | 47%
  ^a^Adapted from Milano et al.[19]
  ^b^Any hypothyroidism (i.e., compensated or uncompensated).
  ^c^Age 14 to 15 y was used as a cutoff because the two studies that analyzed age used different cut-points. Presumably, the risks of hypothyroidism in patients irradiated at ages 14 to 15 y would be intermediate to those shown for ages <14 y and >15 y.
9. The PENTEC research consortium performed a systematic review of radiation-associated hypothyroidism.[20]
  - Among seven cohorts (250 patients), the dose associated with a 50% risk (D50) of hypothyroidism was 39 Gy (95% CI, 34.1–53.2).
  - The risk was 20% for children who received a mean dose of 22 Gy in 2-Gy fractions.

##### Clinical presentation

- Most children treated with radiation therapy who develop hypothyroidism do so within the first 2 to 5 years posttreatment, but new cases can occur later.
- Reports of thyroid dysfunction differ depending on the dose of radiation, the length of follow-up, and the biochemical criteria used to make the diagnosis.[21]
- The most frequently reported abnormalities include the following:
  - Elevated TSH.
  - Depressed T_4_.
  - Elevated TSH and depressed T_4_.
- Central hypothyroidism results from radiation exposure of the hypothalamic pituitary axis; there is typically a low free T_4_ in conjunction with low TSH.
- Compensated hypothyroidism includes an elevated TSH with a normal T_4_ and is asymptomatic. The natural history is unclear, but most endocrinologists support treatment.
- Uncompensated hypothyroidism includes both an elevated TSH and a depressed T_4_.
- Thyroid hormone replacement is beneficial for correction of the metabolic abnormality, and has clinical benefits for cardiovascular, gastrointestinal, and neurocognitive function.

#### Hyperthyroidism

While less common than hypothyroidism, childhood cancer survivors also experience an increased risk of hyperthyroidism.[2,16,22,23]

Evidence (prevalence of and risk factors for hyperthyroidism):

1. CCSS investigators evaluated the prevalence of thyroid disease among 1,791 childhood Hodgkin lymphoma survivors treated between 1970 and 1986 and followed for a median of 14 years.[16]
  - Hyperthyroidism was reported by 5% of survivors, which was eightfold greater than the incidence reported by the controls.
  - Radiation dose of 35 Gy or more to the thyroid was the only risk factor identified for hyperthyroidism.
2. Another CCSS study evaluated the risk of hyperthyroidism in relation to incidental therapeutic radiation dose to the thyroid and pituitary glands.[22]
  - Hyperthyroidism was self-reported by 179 survivors, with 148 cases diagnosed 5 or more years after cancer diagnosis.
  - The cumulative proportion of survivors with hyperthyroidism by 30 years after cancer diagnosis was 2.5% (95% CI, 2.0%–2.9%).
  - Thyroid radiation increased the risk of hyperthyroidism with evidence of a linear thyroid radiation dose-response over the dose range of 0 Gy to 63 Gy.
  - Radiation to the pituitary gland and chemotherapy were not significantly associated with hyperthyroidism.
  - Radiation-associated risk of hyperthyroidism remained elevated longer than 25 years after exposure.

#### Thyroid nodules

The clinical manifestation of thyroid neoplasia among childhood cancer survivors ranges from asymptomatic, small, solitary nodules to large, intrathoracic goiters that compress adjacent structures.

The following factors are linked to an increased risk of thyroid nodule development:

- Radiation dose, time from diagnosis, and female sex.
  - Any radiation field that includes the thyroid is associated with an excess risk of thyroid neoplasms, which may be benign (usually adenomas) or malignant (most often differentiated papillary carcinoma).[2,16,24-27]
  - A CCSS study that included survivors of Hodgkin lymphoma identified time from diagnosis, female sex, and radiation dose of 25 Gy or higher as significant risk factors for thyroid nodule development.[16]
  - Based on a cohort of 3,254 2-year childhood cancer survivors treated before 1986 and monitored for 25 years, the risk of thyroid adenoma increased with the size of the radiation dose to the thyroid during childhood cancer treatment and plateaued at doses exceeding 10 Gy.[25]
  - CCSS investigators performed a nested case-control study to evaluate the magnitude of risk for thyroid cancer over the therapeutic radiation dose range of pediatric cancers. The risk of thyroid cancer increased with radiation doses up to 20 Gy to 29 Gy (OR, 9.8; 95% CI, 3.2–34.8), but declined at doses higher than 30 Gy, consistent with a cell-killing effect.[27]
- Age at time of radiation therapy.
  - Based on the same cohort of 3,254 2-year childhood cancer survivors, the risk of thyroid adenoma per unit of radiation dose to the thyroid was higher if radiation therapy had been delivered before age 5 years. The risk was also higher in individuals who were younger than 40 years at the time of the study.[25]
  - Younger age at time of radiation therapy has also been linked to an excess risk of thyroid carcinoma.[24-27]
- Exposure to 131I-MIBG.
  - During childhood and adolescence, there is an increased risk of developing thyroid nodules, and potentially thyroid cancer, in patients exposed to 131I-MIBG.
  - Clinicians caring for survivors treated with 131I-MIBG should be aware of the risks of developing thyroid dysfunction, thyroid nodules, and thyroid cancer.[28]
- Chemotherapy.
  - An increased risk of thyroid nodules and cancer has also been observed in association with chemotherapy, independent of radiation exposure.[2,24,25]
  - In a pooled study of two cohorts of 16,757 survivors that included 187 patients with secondary thyroid cancer, treatments with alkylating agents, anthracyclines, or bleomycin were associated with a significantly increased risk of thyroid cancer in individuals not exposed to radiation therapy.[29]
  - In the CCSS, the rate ratio of developing thyroid cancer was 2.5 (P < .01) in survivors not treated with thyroid radiation when compared with sibling controls.[2]
  - Areas of active research include defining the precise role of exposure to chemotherapy and developing risk prediction models for thyroid cancer in childhood cancer survivors on the basis of demographic and treatment-related risk factors.[30]

#### Screening for thyroid cancer

- Several studies have demonstrated that ultrasonography is superior to clinical examination for detecting thyroid nodules and thyroid cancers, and they have characterized ultrasonographic features of nodules that are more likely to be malignant.[31-33]
- Primary screening for thyroid neoplasia (beyond physical examination with thyroid palpation) remains controversial because of the lack of data indicating a survival benefit and quality-of-life benefit associated with early detection and intervention.[34,35]
- Because these lesions tend to be indolent, are rarely life-threatening, and may clinically manifest many years after exposure to radiation, there are significant concerns regarding the costs and harms of overscreening.[36]
- Expert panels have refrained from specifically endorsing or discouraging the use of ultrasonography as a screening tool for thyroid cancer and this continues to be an active area of investigation.[37]
- Following a systematic assessment of the evidence, the International Guideline Harmonization Group concluded that initiation of surveillance and the type of surveillance modality (thyroid palpation vs. ultrasonography) should be determined by shared decision-making between the health care provider and survivor after carefully considering the benefits and harms. A decision aid to facilitate discussion accompanies their recommendations.[34]

For information about subsequent thyroid cancers, see the Subsequent Neoplasms section.

#### Posttransplant thyroid dysfunction

Survivors of pediatric hematopoietic stem cell transplant (HSCT) are at increased risk of thyroid dysfunction.[38,39]

- In a retrospective study of a single pediatric transplant unit, 244 pediatric patients were observed over a 20-year period. These patients had undergone HSCT for malignant or nonmalignant diseases between 1999 and 2018. Patients were assessed with a minimum of four thyroid function tests and one or more thyroid ultrasounds sequentially after HSCT.[39]
  - Thyroid complications were detected in 19.7% of patients.
  - The 15-year cumulative incidence of either autoimmune or nonautoimmune thyroid dysfunctions (34%) did not differ statistically between patients who received total-body irradiation (TBI)–based regimens and patients who received chemotherapy-based regimens (P = .23). The cumulative incidence after busulfan-based conditioning was similar to that of TBI (10-year cumulative incidence, 22.2% vs. 25.9%, respectively).
  - The cumulative incidence of nonautoimmune hypothyroidism was statistically higher after busulfan-based conditioning (12.4%) than after other chemotherapy-only–based conditioning regimens (3.1%; P = .02, 5-year cumulative incidence).
  - The overall incidence of thyroid nodules was low for the first 5 years after HSCT (1.9%) but increased steeply over time, with a 15-year cumulative incidence as high as 52.1%. Patients who received TBI-based conditioning regimens had a higher 15-year cumulative incidence of nodules (66.8%) than patients who received chemotherapy-only regimens (33.6%; P = .02).
  - Age older than 10 years at transplant showed a protective effect (HR, 0.42).
  - Sonographic follow-up showed a progressive statistically significant reduction in thyroid anteroposterior diameter among patients who received TBI-based conditioning regimens (P = .005) but not in those who received chemotherapy-only regimens.
- In a report from the Fred Hutchinson Cancer Research Center, the risk of thyroid dysfunction after HSCT was much lower (15%–16%) after fractionated TBI, as opposed to single-dose TBI (46%–48%).[38]
  - The increased risk of thyroid dysfunction did not differ between children receiving a TBI-based or busulfan-based regimen (P = .48).
  - Other high-dose therapies have not been studied.

TSH/TRH deficiency (central hypothyroidism) is discussed with late effects that affect the pituitary gland.

Table 9 summarizes thyroid late effects and the related health screenings.

Table 9. Thyroid Late Effects^a^

Predisposing Therapy | Endocrine/Metabolic Effects | Health Screening
Radiation exposing thyroid gland; thyroidectomy | Primary hypothyroidism | TSH level
Radiation exposing thyroid gland | Hyperthyroidism | Free T_4_ level
Radiation exposing thyroid gland | Hyperthyroidism | TSH level
Radiation exposing thyroid gland, including 131I-MIBG | Thyroid nodules | Thyroid examination
Radiation exposing thyroid gland, including 131I-MIBG | Thyroid nodules | Thyroid ultrasonography

131I-MIBG = Iodine I 131-metaiodobenzylguanidine; T_4_ = thyroxine; TSH = thyroid-stimulating hormone.

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### Hypothalamus-Pituitary Axis

Survivors of childhood cancer are at risk of developing a spectrum of neuroendocrine abnormalities, primarily because of the effect of radiation therapy on the hypothalamus.

- There are two categories of childhood cancer survivors who experience hypothalamus-pituitary dysfunction after radiation—survivors with a CNS tumor and survivors treated for a non-CNS tumor of the head or neck or leukemia and/or individuals with a history of an HSCT.[40]
- In addition, tumor development or surgical resection close to the hypothalamus and/or pituitary gland may induce direct anatomical damage to these structures and result in hypothalamic-pituitary dysfunction.
- Essentially all of the hypothalamic-pituitary axes are at risk.[41-43]

The quality of the literature regarding pituitary endocrinopathy among childhood cancer survivors is often limited by retrospective data collection, small sample size, cohort selection and participation bias, heterogeneity in treatment approach, time since treatment, and method of ascertainment. However, the evidence linking this outcome with radiation therapy, surgery, and tumor infiltration is compelling because affected individuals typically present with metabolic and developmental abnormalities early in follow-up.

The risk of hypothalamus-pituitary dysfunction increases with higher doses of radiation therapy. When the radiation therapy dose exceeds 30 Gy, there is a higher risk of developing hypothalamus-pituitary disorders, including adrenocorticotropic hormone (ACTH) deficiency, luteinizing hormone (LH)/follicle-stimulating hormone (FSH) deficiency, and TSH deficiency.[40]

#### Central diabetes insipidus

Central diabetes insipidus may herald the diagnosis of craniopharyngioma, suprasellar germ cell tumor, or Langerhans cell histiocytosis.[44-46]

- Diabetes insipidus may occur as an isolated pituitary deficiency at presentation of sellar/suprasellar tumors, although additional pituitary hormone deficiencies may develop with tumor progression.
- More commonly, diabetes insipidus occurs in the context of panhypopituitarism caused by the effects of the tumor on the hypothalamic-pituitary-adrenal (HPA) axis, or as a consequence of surgical procedures undertaken for local tumor control.
- Central diabetes insipidus is unlikely to occur as a late effect from surgical tumor resection past 2 years of follow-up.[47] Its emergence past that time should prompt assessment for tumor changes or other causes.
- Central diabetes insipidus has not been reported as a late effect of cranial irradiation in childhood cancer survivors.[3]

#### Anterior pituitary hormone deficiency

Deficiencies of anterior pituitary hormones and major hypothalamic regulatory factors are common late effects among survivors treated with cranial irradiation.[43]

Evidence (prevalence of anterior pituitary hormone deficiency):

1. Young patients with brain tumors are particularly vulnerable to hypothalamic-pituitary dysfunction. One study included 718 childhood brain tumor survivors who were monitored for a median of 7.9 years.[48]
  - No differences were observed in the prevalence of hypothalamic-pituitary dysfunction among infants (0–1 years), toddlers (≥1–3 years), or older age groups at diagnosis, despite the fact that radiation therapy was less frequently used in infants.
  - Radiation exposure (OR, 16.44; 95% CI, 8.93–30.27), suprasellar tumor location (OR, 44.76; 95% CI, 19.00–105.49), and younger age (OR, 1.11; 95% CI, 1.05–1.18) were associated with hypothalamic dysfunction.
  - Infant and toddler brain tumor survivors showed more weight gain (P < .0001) and smaller height standard deviation score (SDS) (P = .001) during follow-up than survivors diagnosed at an older age.
  - Among non-irradiated survivors, those who were infants and toddlers at diagnosis were significantly more frequently diagnosed with TSH, ACTH, and antidiuretic hormone (ADH) deficiency, compared with survivors diagnosed at an older age, presumably caused by systemic therapies or the trauma of neurosurgery.
2. A study targeting more refined data on the radiation doses associated with pituitary insufficiency analyzed 102 patients treated for tumors that included radiation therapy exposures (CNS, head and neck, hematologic malignancies) between 2008 and 2019. The median (interquartile range [IQR]) age at radiation therapy was 9.0 years (6.0–12.0 years), and the median follow-up was 5.7 years (3.5–9.1 years). Most patients received focal brain radiation therapy (36.3%) or TBI (32.4%). The most frequent diagnoses were ALL (25.5%) and medulloblastoma (17.6%).[49]
  - Most patients developed pituitary insufficiency (64 patients; 62.7%). Forty-one percent of patients had one hormone deficiency and 38% had two hormone deficiencies.
  - Growth hormone deficiency (58 patients; 56.9%) and TSH deficiency (32 patients; 31.4%) were most common.
  - Patients who developed pituitary insufficiency had received a higher maximum pituitary dose (median [IQR], 44.0 Gy [20.4–54.0] vs. 18.2 Gy [14.4–52.6]; P = .008). Doses of 40 to 49 Gy or higher than 50 Gy led to a higher cumulative incidence rate than doses lower than 20 Gy (HR, 4.07; P < .001 and HR, 3.04; P < .001, respectively).
  - However, even at lower dose bands, levels of pituitary insufficiency were significant. The 5-year cumulative incidence was higher than 30% for growth hormone deficiency with doses lower than 20 Gy and for TSH deficiency with doses of 20 to 29 Gy.
3. In a single-institution study, 1,713 adult survivors of childhood cancers and brain tumors (median age, 32 years) were monitored for a median follow-up of 25 years.[42]
  - The prevalence of hypothalamic-pituitary axis disorders was 56.4% in individuals exposed to cranial radiation therapy at doses of 18 Gy or higher.
4. A study of 3,141 childhood cancer survivors who were systematically evaluated for hypothalamic-pituitary disorders at a median follow-up of 24.1 years reported the following:[50]
  a. For patients who were treated with hypothalamic-pituitary radiation therapy (n = 1,089), the following was observed:
    - The estimated prevalence of growth hormone deficiency was 40.2%.
    - The estimated prevalence of TSH deficiency was 11.1%.
    - The estimated prevalence of LH/FSH deficiency was 10.6%.
    - The estimated prevalence of ACTH deficiency was 3.2%.
    - The estimated prevalence of central precocious puberty was 0.9%.
  b. For patients who did not receive hypothalamic-pituitary radiation therapy, the estimated prevalence of growth hormone deficiency was 6.2% and less than 1% for the other hypothalamic-pituitary disorders.
  c. Clinical factors independently associated with hypothalamic-pituitary disorders included the following:
    - Hypothalamic-pituitary radiation therapy (even at relatively low doses, except for ACTH deficiency which was not observed until >30 Gy).
    - Alkylating agents (growth hormone deficiency, LH/FSH deficiency).
    - Intrathecal chemotherapy (growth hormone deficiency).
    - Hydrocephalus with shunt placement (growth hormone deficiency, LH/FSH deficiency).
    - Seizures (TSH deficiency, ACTH deficiency).
    - Stroke (growth hormone deficiency, TSH deficiency, LH/FSH deficiency, ACTH deficiency).
  d. Adverse outcomes associated with hypothalamic-pituitary disorders included the following:
    - Short stature (growth hormone deficiency, TSH deficiency).
    - Severe bone mineral deficit (growth hormone deficiency, LH/FSH deficiency).
    - Obesity (LH/FSH deficiency).
    - Frailty (growth hormone deficiency).
    - Impaired physical health-related quality of life (TSH deficiency).
    - Sexual dysfunction (LH/FSH deficiency).
    - Impaired memory and processing speed (growth hormone deficiency, TSH deficiency).

The International Late Effects of Childhood Cancer Guideline Harmonization Group (IGHG) consisting of 42 interdisciplinary international experts performed a systematic literature search on hypothalamic-pituitary axis surveillance in childhood cancer survivors.[40]

- They noted that hypothalamic-pituitary axis radiation exposure increased the risk for hypothalamic-pituitary dysfunction, with a dose dependent relationship. Doses of radiation therapy higher than 18 Gy are associated with a higher risk for growth hormone deficiency and central precocious puberty.
- Deficiencies in ACTH, TSH, and LH/FSH generally occur after doses higher than 30 Gy.
- The panel noted that childhood cancer survivors who have had local tissue injury to the hypothalamic-pituitary region are at risk of developing hypothalamic-pituitary dysfunction from the time of diagnosis or surgery for a brain tumor located near or within the hypothalamic-pituitary region or from occurrence of hydrocephalus (specifically at risk for growth hormone deficiency and central precocious puberty).
- Individuals exposed to radiation are at risk of developing hypothalamic-pituitary dysfunction one year from completion of radiation therapy.
- Childhood cancer survivors remain particularly at risk of growth hormone deficiency for at least 15 years after cancer diagnosis or treatment exposure. The risk beyond 15 years depends on individual patient factors. For central precocious puberty, patients remain at risk until age 8 years in girls and age 9 years for boys.

The six anterior pituitary hormones and their major hypothalamic regulatory factors are outlined in Table 10.

Table 10. Anterior Pituitary Hormones and Major Hypothalamic Regulatory Factors

Pituitary Hormone | Hypothalamic Factor | Hypothalamic Regulation of the Pituitary Hormone
Growth hormone (GH) | GH-releasing hormone | +
Growth hormone (GH) | Somatostatin | –
Prolactin | Dopamine | –
Luteinizing hormone (LH) | Gonadotropin-releasing hormone | +
Follicle-stimulating hormone (FSH) | Gonadotropin-releasing hormone | +
Thyroid-stimulating hormone (TSH) | Thyroid-releasing hormone | +
Thyroid-stimulating hormone (TSH) | Somatostatin | –
Adrenocorticotropic hormone (ACTH) | Corticotropin-releasing hormone | +
Adrenocorticotropic hormone (ACTH) | Vasopressin | +

(–) = inhibitory; (+) = stimulatory.

#### Growth hormone deficiency

Growth hormone deficiency is the most common and often the first anterior pituitary deficit to occur after cranial radiation therapy. In childhood survivors of CNS tumors, the overall prevalence of growth hormone deficiency is 12.5%.[3]

- The risk increases with radiation dose and time since treatment.
- Growth hormone deficiency can result from relatively low doses of cranial radiation.[51]
- Growth hormone deficiency can develop after 18 Gy to 24 Gy of cranial radiation, which is used to treat patients with ALL and lymphoma. The higher the radiation dose, the earlier that growth hormone deficiency will occur after treatment.[52]
- Approximately 60% to 80% of pediatric patients with brain tumors who received radiation therapy doses higher than 30 Gy will have impaired serum growth hormone response to provocative stimulation, usually within 5 years of treatment.[53,54]

Evidence (radiation-dose response relationship of growth hormone deficiency in childhood brain tumor survivors):

1. In a report of 156 patients with medulloblastoma who were treated from 2003 to 2013 in the SJMB03 study, the following was observed:[55]
  - The 5-year cumulative incidence of growth hormone deficiency was 68.9%, and the cumulative incidence of growth hormone replacement was 48.1%.
  - Growth hormone deficiency was associated with increased hypothalamus dose (HR, 1.035; P = .0055) in average-risk patients and in high-risk patients who had a cerebrospinal fluid shunt (HR, 2.532; P = .0049).
2. A study of conformal radiation therapy (CRT) in children with CNS tumors indicates that growth hormone insufficiency can usually be demonstrated within 12 months of radiation therapy, depending on hypothalamic dose-volume effects.[56]
3. In a report featuring data from 118 patients with localized brain tumors who were treated with radiation therapy, peak growth hormone was modeled as an exponential function of time after CRT and mean radiation dose to the hypothalamus.[54]
  - The average patient was predicted to develop growth hormone deficiency with the following combinations of time after CRT and mean dose to the hypothalamus: 12 months and more than 60 Gy; 36 months and 25 Gy to 30 Gy; and 60 months and 15 Gy to 20 Gy.
  - A cumulative dose of 16.1 Gy to the hypothalamus would be considered the mean radiation dose causing a 50% risk of growth hormone deficiency at 5 years (TD50/5) (see Figure 7).
  Figure 7. Peak growth hormone (GH) according to hypothalamic mean dose and time after start of radiation. According to equation 2, peak GH = exp{2.5947 + time × [0.0019 − (0.00079 × mean dose)]}. Thomas E. Merchant, Susan R. Rose, Christina Bosley, Shengjie Wu, Xiaoping Xiong, and Robert H. Lustig, Growth Hormone Secretion After Conformal Radiation Therapy in Pediatric Patients With Localized Brain Tumors, Journal of Clinical Oncology, volume 29, issue 36, pages 4776-4780. Reprinted with permission. © (2011) American Society of Clinical Oncology. All rights reserved.
  Graph shows peak growth hormone (in ng/mL) according to hypothalamic mean dose and time (in months) after start of irradiation.
4. A PENTEC review reported on the risk of growth hormone deficiency for childhood cancer survivors treated with radiation therapy.[20]
  - The normal tissue complication probability modeling for growth hormone deficiency (18 cohorts, 545 patients) found that the D50 was 24.9 Gy (95% CI, 20.9–28.0).
  - The normal tissue complication probability model fit for whole-brain irradiation in children with a median age of older than 5 years indicated a 20% risk of growth hormone deficiency for patients who received a mean dose of 21 Gy in 2-Gy fractions to the hypothalamic-pituitary axis.

Evidence (risk of growth deficits in childhood cancer survivors):

1. One study evaluated 127 patients with ALL treated with 24 Gy, 18 Gy, or no cranial radiation therapy (treatment era, 1980s–1990s).[57]
  - The change in height, compared with population norms expressed as the SDS, was significant for all three groups. The dose response was -0.49 ± 0.14 for the group that did not receive radiation therapy, -0.65 ± 0.15 for the group that received 18 Gy of radiation therapy, and -1.38 ± 0.16 for the group that received 24 Gy of radiation therapy.
2. Survivors of childhood ALL who are treated with chemotherapy alone are also at increased risk for adult short stature, although the risk is highest for those treated with cranial and craniospinal radiation therapy at a young age.[58] In a cross-sectional study, attained adult height was determined for 2,434 ALL survivors participating in the CCSS.
  - All survivor treatment exposure groups (chemotherapy alone and chemotherapy with cranial or craniospinal radiation therapy) had decreased adult height and an increased risk of adult short stature (height SDS < -2), compared with siblings (P < .001).
  - Compared with siblings, the risk of short stature for survivors treated with chemotherapy alone was elevated (OR, 3.4; 95% CI, 1.9–6.0).
  - Among survivors, significant risk factors for short stature included diagnosis of ALL before puberty, higher-dose cranial radiation therapy (≥20 Gy vs. <20 Gy), any radiation therapy to the spine (which effects vertebral bodies), and female sex.
3. The impact of chemotherapy alone on growth in 67 survivors treated with contemporary regimens for ALL was statistically significant at -0.59 SD. The loss of growth potential did not correlate with growth hormone status in this study, further highlighting the participation of other factors in the growth impairments observed in this population.[59]
4. In a longitudinal study of 372 survivors of ALL who were treated on a single-institution chemotherapy-only trial, the following were observed:[60]
  - Height z-scores declined during treatment and improved after therapy.
  - Younger age at diagnosis (2 to <10 years), low-risk ALL status, white blood cell count below 50 × 10^9^/L at diagnosis, or CNS-negative status were associated with significant improvements in z-scores for height during the off-therapy period compared with those older at diagnosis (age ≥10 years), those with standard-risk/high-risk ALL status, those with a white blood cell count of 50 × 10^9^/L or higher, or CNS-positive status.
  - The loss in height potential in older patients was attributed to attenuation of the growth spurt during treatment without improvement after therapy and to chemotherapy intensity in patients with standard- or high-risk disease features.
5. A French CCSS study evaluated risk factors for short adult height and growth hormone deficiency in 2,965 childhood cancer survivors using clinical and treatment data available in medical records. Patients treated with growth hormones (6.4%) were excluded.[61]
  - Independent risk factors for short adult height included being young at the time of cancer treatment (RR, 0.9 per year of age), having a short height at diagnosis (≤2 SDS: RR, 6.7), and having received treatment with pituitary radiation (5–20 Gy: RR, 4.2; 20–40 Gy: RR, 10.2; ≥40 Gy: RR, 19.5), busulfan (RR, 4.5), or more than 300 mg/m^2^ of lomustine (300–600 mg/m^2^: RR, 4.2 and ≥600 mg/m^2^: RR, 9.1).
  - Children who were treated with 15 Gy or higher of radiation to 90% or more volume of seven or more vertebrae without pituitary irradiation had an increased risk of short adult stature (RR, 4.6). This risk increased by 1.3-fold to 2.4-fold if they also received pituitary radiation therapy.
6. A St. Jude Children's Research Hospital investigation evaluated long-term (median follow-up, 10.2 years) height outcomes among 212 pediatric patients with CNS embryonal tumors who were treated with CSI at 23.4 Gy (n = 147) or 36 Gy or higher (n = 65).[62]
  - Compared with U.S. standards, mean final height z-scores at age 18 years were -1.3 for female and -1.5 for male survivors.
  - Factors associated with risk of height impairment included younger age at the time of CSI, higher CSI dose, and female sex.
  - Factors associated with higher growth rates before the age of 15 years included older age at CSI, male sex, CSI dose lower than 36 Gy, replacement therapy for growth hormone and central adrenal insufficiency, and White race.

##### Growth after hematopoietic stem cell transplant (HSCT)

- Children who undergo HSCT with TBI have a significant risk of both growth hormone deficiency and the direct effects of radiation on skeletal development.[63-65]
- The risk of growth hormone deficiency is increased with single-dose TBI as opposed to fractionated TBI, pretransplant cranial irradiation, female sex, and posttreatment complications such as graft-versus-host disease (GVHD).[63-65]
- Hyperfractionation of the TBI dose markedly reduces risk in patients who have not undergone cranial irradiation for CNS leukemia prophylaxis or therapy.[66]
- Regimens containing busulfan and cyclophosphamide appear to increase risk in some studies,[65,67] but not others.[68]

Evidence (growth hormone deficiency in childhood HSCT survivors):

1. The late effects that occur after HSCT have been studied by the Late Effects Working Party of the European Group for Blood and Marrow Transplantation. Among 181 patients with aplastic anemia, leukemias, and lymphomas who underwent HSCT before puberty, the following results were observed:[69,70]
  - An overall decrease in final height–SDS value was found, compared with height at transplant and genetic height. The mean loss of height is estimated to be approximately 1 height–SDS (6 cm), compared with the mean height at time of HSCT and mean genetic height.
  - The type of transplant, GVHD, and growth hormone or steroid treatment did not influence final height.
  - TBI (single-dose more than fractionated-dose radiation therapy), male sex, and young age at transplant were found to be major factors for long-term height loss.
  - Most patients (140 of 181) reached adult height within the normal range of the general population.
2. Growth hormone deficiency has been reported after lower doses with a single fraction of 10 Gy and fractionated doses of 12 to 18 Gy of TBI.[71]

##### Growth hormone replacement therapy

- Growth hormone replacement therapy provides the benefit of optimizing height outcomes among children who have not reached skeletal maturity.[43] The diagnosis requires specialized dynamic testing.[43,72]
- Treatment with recombinant growth hormone (rGH) replacement therapy is generally delayed until 12 months after successful completion of cancer or brain tumor treatments and after a multidisciplinary discussion involving the prescribing pediatric endocrinologist, the primary oncologist, and other providers selected by the patient or family.[73]
- Safety concerns pertaining to the use of rGH in childhood cancer survivors have primarily been related to the mitogenic potential of the growth hormone stimulating tumor growth in a population with an increased risk of second neoplasms.[74] Most studies that report these outcomes, however, are limited by selection bias and small sample size.

Evidence (subsequent neoplasm risk after growth hormone deficiency replacement therapy):

1. One study evaluated 361 growth hormone–treated cancer survivors enrolled in the CCSS and compared risk of recurrence, risk of subsequent neoplasm, and risk of death among survivors who did and did not receive treatment with growth hormone.[75]
  - The RR of disease recurrence was 0.83 (95% CI, 0.37–1.86) for growth hormone–treated survivors.
  - Growth hormone–treated participants were diagnosed with 15 subsequent neoplasms, all solid tumors, for an overall RR of 3.21 (95% CI, 1.88–5.46). This was mainly due to a small excess number of subsequent neoplasms observed in survivors of acute leukemia.[75]
  - With prolonged follow-up, the elevation of subsequent cancer risk resulting from growth hormone diminished.[76]
  - Compared with survivors not treated with growth hormone, those who were treated had a twofold excess risk of developing a subsequent neoplasm (RR, 2.15; 95% CI, 1.33–3.47; P < .002). Meningiomas were the most commonly observed neoplasms (9 of 20 tumors).[75]
2. A study from the CCSS reported on the risk of subsequent CNS neoplasms after a longer period of follow-up.[77]
  - The adjusted rate ratio of meningioma and gliomas in growth hormone–treated survivors of CNS tumors was 1.0 (95% CI, 0.6–1.8; P = .94), when compared with CNS tumor survivors who were not treated with growth hormone. This finding indicates negligible differences between the two groups for this particular risk.
3. A review of existing data suggests that treatment with growth hormone is not associated with an increased risk of CNS tumor progression or recurrence, or new or recurrent leukemia.[78]

In general, the data addressing subsequent malignancies among childhood cancer survivors treated with growth hormone therapy should be interpreted with caution given the small number of events.[43,56,73-75,79,80]

As outlined in a consensus statement by the Growth Hormone Research Society, areas of uncertainty include the safety of growth hormone in children with cancer-predisposing conditions, its use in growth hormone–deficient children who are receiving maintenance therapy, and the overall benefit-risk ratio in adult survivors.[81]

#### Disorders of LH and FSH

- Pubertal development can be adversely affected by cranial radiation therapy.
- Doses higher than 18 Gy can result in central precocious puberty, while doses higher than 30 Gy to 40 Gy may result in LH/FSH deficiency.[50]

##### Central precocious puberty

###### Prevalence and risk factors

- Central precocious puberty is among the most common hypothalamic-pituitary dysfunctions. The prevalence varies across studies because of study cohort composition and method of ascertainment.[3,82,83]
- In the SJMB03 study, 156 children and adolescents with medulloblastoma were treated with surgery, risk-adapted photon craniospinal irradiation, and dose-intensive chemotherapy.[55]
  - The 5-year cumulative incidence of precocious puberty was 2.0%.
- Children with CNS tumors within or near the hypothalamic-pituitary axis (including those with neurofibromatosis type 1) or those treated with cranial radiation are most vulnerable.[3]
  - In a study of 178 childhood brain tumor survivors (median follow-up, 6.6 years), precocious puberty developed in 12.2% of survivors, with a 5-year cumulative incidence of 4.0%.[3]
  - Central precocious puberty has been reported in children receiving cranial irradiation in doses of 18 Gy or higher.[82,84,85]
- Hydrocephalus also increases the risk of central precocious puberty.[86]

###### Diagnosis

- Central precocious puberty is defined by the onset of pubertal development before age 8 years in girls and 9 years in boys as a result of the premature activation of the hypothalamic-pituitary-gonadal axis.
- Assessment of puberty cannot be performed using testicular volume measurements in boys exposed to chemotherapy or direct radiation to the testes, given the toxic effect of these treatments on germ cells and repercussions on gonadal size.[87]
- The staging of puberty in males within this population relies on the presence of other signs of virilization, such as the presence of pubic hair and the measurement of morning plasma testosterone and LH levels.[87]

###### Treatment and outcomes associated with central precocious puberty

- Aside from the adjustment and psychosocial challenges associated with early pubertal development, precocious puberty can lead to the rapid closure of the skeletal growth plates and short stature. This deleterious effect can be further potentiated by growth hormone deficiency.[82,87]
- The increased growth velocity induced by pubertal development can mask concurrent growth hormone deficiency with seemingly normal growth velocity; this occurrence may mislead care providers.[87]
- The impact of central precocious puberty on linear growth can be ascertained by assessing the degree of skeletal maturation (or bone age) using an x-ray of the left hand.[88]
- Delaying the progression of puberty relies on the use of various gonadotropin-releasing hormone agonist preparations. This approach has been shown to improve growth prospects, especially when other pituitary abnormalities, including growth hormone deficiency, are concurrently treated.[43,89]

##### LH/FSH deficiency

- LH/FSH deficiency (also referred to as hypogonadotropic hypogonadism) can manifest through pubertal delay (after age 13 years in girls and 14 years in boys), arrested puberty, or symptoms of decreased sex hormone production, depending on age and pubertal status at the time of diagnosis.
- The risk of LH/FSH deficiency is highest among patients treated with cranial radiation at doses greater than or equal to 30 Gy. LH/FSH deficiency following the exposure to lower doses can occur at delayed time points.[4]
- With higher doses of cranial radiation therapy (>35 Gy), deficiencies in LH/FSH can be seen, with a cumulative incidence of 10% to 20% at 5 to 10 years posttreatment.[4,86]
- The treatment of LH/FSH deficiency relies on sex-hormone replacement therapy adjusted to age and pubertal status.[43]

#### TSH/TRH deficiency

TSH deficiency (also referred to as central hypothyroidism) in survivors of childhood cancer can have profound clinical consequences and be underappreciated. Among survivors of head and neck tumors treated with radiation therapy potentially exposing the hypothalamic-pituitary region and the thyroid gland, hypothyroidism may result from TRH and/or TSH deficiency (central hypothyroidism), thyroid gland dysfunction (primary hypothyroidism), or a combination of central and primary causes.

##### Prevalence and risk factors

- The risk of TSH deficiency is highest among patients treated with cranial radiation at doses of 30 Gy or higher. TSH deficiency following the exposure to lower doses can occur at delayed time points.[4]
- The cumulative incidence of TSH deficiency was 23% (± 8%) among embryonal brain tumor survivors treated with risk-adapted CSI, conformal primary site irradiation, and high-dose chemotherapy. Radiation dose to the hypothalamus in excess of 42 Gy is associated with an increased risk of developing TSH deficiency (44% ± 19% for a dose of ≥42 Gy and 11% ± 8% for a dose of <42 Gy).[90]
- In a report of 156 children and adolescents with medulloblastoma who were treated with surgery, risk-adapted photon craniospinal irradiation, and dose-intensive chemotherapy between 2003 and 2013, the incidence of hypothyroidism was 48.4%.[55]
  - In average-risk patients, hypothyroidism was associated with younger age (HR, 0.902; P = .0070), hypothalamus dose (HR, 1.039; P = .0273), and thyroid dose (HR, 1.070; P = .0263). The mean radiation therapy dose was 34.8 Gy (standard deviation [SD], 7.5) to the hypothalamus and 17.4 Gy (SD, 5.4) to the thyroid.
  - In high-risk patients, hypothyroidism was associated with increased hypothalamus dose (HR, 1.068; P = .0671) and thyroid dose (HR, 1.050; P = .0515). The mean radiation therapy dose was 47.8 Gy (SD, 4.87) to the hypothalamus and 25.8 Gy (SD, 7.2) to the thyroid.
  - The investigators were not able to reliably distinguish between central and primary hypothyroidism, but they estimated that 8 of 85 patients were initially diagnosed with central hypothyroidism.
- Among medulloblastoma survivors treated with photon (median follow-up, 9.6 years) or proton (median follow-up, 3.8 years) radiation therapy, primary hypothyroidism developed in 12 of 54 patients (22%) after photon radiation therapy and 3 of 41 patients (7%) after proton radiation therapy (HR, 2.1; P = .27). Central hypothyroidism (TSH deficiency) developed in 13 of 54 patients (24%) after photon radiation therapy and 4 of 41 patients (10%) after proton radiation therapy (HR, 2.16, P = .18).[91]
- Among 118 medulloblastoma survivors (median follow-up, 5.6 years), the estimated cumulative incidence of hypothyroidism was 35.8% (95% CI, 26.7%–47.1%) by 5 years after radiation therapy.[18]
  - The median time from the end of radiation therapy to the development of hypothyroidism was 2.1 years (range, 0.1–7.1 years) after proton radiation therapy and 2.9 years (range, 0.8–7.2 years) after photon radiation therapy.
  - The rate of hypothyroidism (HR, 2.36; 95% CI, 1.11–5.02) was higher in patients treated with photon radiation therapy than in those treated with proton radiation therapy.
  - Differences in hypothyroidism risk by radiation modality were largely attributed to higher rates of primary hypothyroidism after photon radiation therapy (HR, 4.61; 95% CI, 1.20–17.66).
- Patients with central hypothyroidism should undergo testing for other hypothalamic-pituitary deficiencies before thyroid replacement. Thyroid replacement can enhance the clearance of cortisol, which exacerbates any underlying adrenal insufficiency and contributes to the possibility of adrenal crisis.
- In a study of 189 children and young adults (aged <26 years) with brain tumors who were treated with proton radiation therapy, the 4-year actuarial rate of hypothyroidism was 20.1%. Ninety percent of the cases were related to central TSH deficiency.[17]

##### Clinical presentation and diagnosis

- Symptoms of central hypothyroidism (e.g., asthenia, edema, drowsiness, and skin dryness) may have a gradual onset and go unrecognized until thyroid replacement therapy is initiated.
- In addition to delayed puberty and slow growth, hypothyroidism may cause fatigue, dry skin, constipation, increased sleep requirement, and cold intolerance.
- Individuals with TSH deficiency usually have low plasma free T_4_ levels and either low or inappropriately normal TSH levels. Declining free T4 levels within the normal range may also be predictive of TSH deficiency. Clinicians should not hesitate to reassess survivors with this pattern of thyroid function, especially in the presence of symptoms of hypothyroidism.[92]
- Mixed primary and central hypothyroidism can also occur because of separate injuries to the thyroid gland and the hypothalamus (e.g., radiation injury to both structures), leading to mildly elevated TSH values despite the contribution of hypothalamic-pituitary deficits to hypothyroidism in affected individuals.

##### Management of TSH deficiency

- Thyroid hormone replacement therapy using levothyroxine represents the mainstay of treatment of TSH deficiency.
- The dose of levothyroxine needs to be adjusted solely using plasma free T_4_ levels. The levels of TSH are expected to remain low during therapy, given the central nature of this deficiency.
- Central hypothyroidism should not be treated before assessment of the functioning of other hypothalamic-pituitary deficiencies, because it could precipitate an adrenal crisis in patients with ACTH deficiency.

#### ACTH deficiency

##### Prevalence and risk factors

- ACTH deficiency is less common than other neuroendocrine deficits but should be suspected in patients who have a history of brain tumors (regardless of therapy modality), cranial radiation therapy, growth hormone deficiency, or central hypothyroidism.[43,90,93,94]
- ACTH deficiency develops almost exclusively in survivors previously exposed to hypothalamic-pituitary doses of 30 Gy or greater.
  - The cumulative incidence of ACTH deficiency was 38% (± 6%) among embryonal brain tumor survivors treated with risk-adapted CSI, conformal primary site irradiation, and high-dose chemotherapy. ACTH status was not affected by the dose of radiation therapy administered to the hypothalamus (median, 42.2 Gy for no ACTH deficiency vs. 41.3 Gy for ACTH deficiency).[90]
  - In a study of 189 children and young adults (aged <26 years) with brain tumors who were treated with proton radiation therapy, the 5-year actuarial rate of ACTH deficiency was 8%, occurring almost exclusively after ≥40 Gy to the hypothalamus and pituitary.[17]
- One report included 156 children and adolescents with medulloblastoma who were treated with surgery, risk-adapted photon craniospinal irradiation, and dose-intensive chemotherapy in the SJMB03 study. The 5-year cumulative incidence of adrenal insufficiency was 13.0%.[55] Adrenal insufficiency was associated with increased hypothalamus dose (HR, 1.112; P < .0001).
- Although uncommon, ACTH deficiency can occur in patients treated with intracranial radiation doses of less than 24 Gy and in patients with non-CNS tumors or hematological malignancies distant from the hypothalamic-pituitary region. The use of glucocorticoid therapy in treatment protocols may also be associated with steroid-induced adrenal insufficiency, which in some cases may be prolonged.[95-97]
- In a PENTEC report on ACTH deficiency (6 cohorts, 230 patients), the dose associated with a 50% risk was 61 Gy (95% CI, 44.7–119.4).[20] The risk of ACTH deficiency was 20% in children who received a mean dose of 34 Gy in 2-Gy fractions to the hypothalamus-pituitary axis.

##### Diagnosis and management

- The diagnosis of ACTH deficiency should be suspected when low plasma levels of morning cortisol are measured (a screening cortisol level collected at 8 AM that is 10 µg/dL or more is reassuring for ACTH sufficiency, whereas a value of 5 µg/dL or lower is suspicious for insufficiency).
- Confirmation is necessary using dynamic testing such as the low-dose ACTH stimulation test.[93]
- Because of the substantial risk of central adrenal insufficiency among survivors treated with cranial radiation doses exceeding 30 Gy to the hypothalamic-pituitary axis, endocrine monitoring with periodic dynamic testing as clinically indicated is recommended for this high-risk group.[43]
- Patients with partial ACTH deficiency may have only subtle symptoms unless they become ill.[43]
- Illness can disrupt these patients’ usual homeostasis and cause a more severe, prolonged, or complicated course than expected. As in complete ACTH deficiency, incomplete or unrecognized ACTH deficiency can be life-threatening during concurrent illness.
- The treatment of ACTH deficiency relies on replacement with hydrocortisone, including stress dosing in situations of illness to adjust to the body’s physiologically increased need for glucocorticoids.[43]

#### Hyperprolactinemia

- Hyperprolactinemia has been described in patients who received radiation therapy to the hypothalamus in doses higher than 50 Gy or who underwent surgery that disrupted the integrity of the pituitary stalk.[98]
- Primary hypothyroidism may lead to hyperprolactinemia as a result of hyperplasia of thyrotrophs and lactotrophs, presumably caused by TRH hypersecretion.
- The prolactin response to TRH is usually exaggerated in these patients.[51,99]
- Hyperprolactinemia may result in delayed puberty, galactorrhea, menstrual irregularities, loss of libido, hot flashes, infertility, and osteopenia. Hyperprolactinemia resulting from cranial radiation therapy is rarely symptomatic and is frequently associated with hypogonadism (both central and primary).
- Hyperprolactinemia rarely requires treatment.[100]

Table 11 summarizes pituitary gland late effects and the related health screenings.

Table 11. Pituitary Gland Late Effects^a^

Predisposing Therapy | Endocrine/Metabolic Effects | Health Screening
Tumor or surgery affecting hypothalamus/pituitary. Radiation exposing hypothalamic-pituitary axis. | Growth hormone deficiency | Assessment of nutritional status
Tumor or surgery affecting hypothalamus/pituitary. Radiation exposing hypothalamic-pituitary axis. | Growth hormone deficiency | Height, weight, BMI, Tanner stage^b^
Tumor or surgery affecting hypothalamus/pituitary or optic pathways; hydrocephalus. Radiation exposing hypothalamic-pituitary axis. | Precocious puberty | Height, weight, BMI, Tanner stage^b^
Tumor or surgery affecting hypothalamus/pituitary or optic pathways; hydrocephalus. Radiation exposing hypothalamic-pituitary axis. | Precocious puberty | FSH, LH, estradiol, or testosterone levels
Tumor or surgery affecting hypothalamus/pituitary. Radiation exposing hypothalamic-pituitary axis. | Gonadotropin deficiency | History: puberty, sexual function
Tumor or surgery affecting hypothalamus/pituitary. Radiation exposing hypothalamic-pituitary axis. | Gonadotropin deficiency | Examination: Tanner stage^b^
Tumor or surgery affecting hypothalamus/pituitary. Radiation exposing hypothalamic-pituitary axis. | Gonadotropin deficiency | FSH, LH, estradiol or testosterone levels
Tumor or surgery affecting hypothalamus/pituitary. Radiation exposing hypothalamic-pituitary axis. | Central adrenal insufficiency | History: failure to thrive, anorexia, episodic dehydration, hypoglycemia, lethargy, unexplained hypotension
Tumor or surgery affecting hypothalamus/pituitary. Radiation exposing hypothalamic-pituitary axis. | Central adrenal insufficiency | Endocrine consultation for those with radiation dose ≥30 Gy
Radiation exposing hypothalamic-pituitary axis. | Hyperprolactinemia | History/examination: galactorrhea
Radiation exposing hypothalamic-pituitary axis. | Hyperprolactinemia | Prolactin level
Radiation exposing hypothalamic-pituitary axis. | Overweight/obesity | Height, weight, BMI
Radiation exposing hypothalamic-pituitary axis. | Overweight/obesity | Blood pressure test
Radiation exposing hypothalamic-pituitary axis. | Components of metabolic syndrome (abdominal obesity, hypertension, dyslipidemia, impaired glucose metabolism) | Fasting blood glucose level and lipid profile
Tumor or surgery affecting hypothalamus/pituitary. Radiation exposing hypothalamic-pituitary axis. | Central hypothyroidism | TSH^c^ free thyroxine (free T_4_) level

BMI = body mass index; FSH = follicle-stimulating hormone; LH = luteinizing hormone; T_4_ = thyroxine; TSH = thyroid-stimulating hormone.

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

^b^Testicular volume measurements are not reliable in the assessment of pubertal development in boys exposed to chemotherapy or direct radiation to the testes.

^c^Appropriate only at diagnosis. TSH levels are not useful for follow-up during replacement therapy.

### Testis and Ovary

Testicular and ovarian hormonal functions are discussed in the Late Effects of the Reproductive System section of this summary.

### Metabolic Syndrome

An increased risk of metabolic syndrome or its components has been observed among survivors of childhood cancer. The evidence for this outcome ranges from clinically manifested conditions that are self-reported by survivors to retrospectively assessed data in medical records and hospital registries to systematic clinical evaluations of clinically well-characterized cohorts. Studies have been limited by cohort selection and participation bias, heterogeneity in treatment approach, time since treatment, and method of ascertainment. Despite these limitations, compelling evidence indicates that metabolic syndrome is highly associated with cardiovascular events and mortality.

Definitions of metabolic syndrome are evolving but generally include a combination of central (abdominal) obesity with at least two of the following features:[101]

- Hypertension.
- Atherogenic dyslipidemia (elevated triglycerides, reduced high-density lipoprotein [HDL] cholesterol).
- Abnormal glucose metabolism (fasting hyperglycemia, hyperinsulinism, insulin resistance, diabetes mellitus type 2).

Evidence (prevalence of and risk factors for metabolic syndrome in childhood cancer survivors):

1. Investigators assessed the prevalence and determinants of metabolic syndrome in the Dutch Childhood Cancer Survivors Study (DCCSS) LATER 2 cohort. A total of 2,338 adult survivors of childhood cancer were assessed and compared with 132,226 adults from the Lifelines cohort. These individuals did not have histories of cancer.[102]
  - Survivors showed a twofold increased risk of metabolic syndrome when compared with adults who did not have histories of cancer. This increased risk was mostly derived from an increased risk of dyslipidemia (increased triglycerides and/or low HDL-C levels).
  - A high prevalence of metabolic syndrome (19.1%) was identified in this young survivor cohort (median age, 34.7 years).
  - Other factors associated with metabolic syndrome were smoking (OR, 1.46), reduced physical activity (OR, 1.48), abdominal radiation therapy (OR, 2.13; >30 Gy), cranial radiation therapy (OR for 1–25 Gy, 2.89; OR for >25 Gy, 2.44), total-body irradiation (OR, 6.17), and underlying central nervous system tumor (OR, 1.78).
2. French investigators evaluated the overall and age-specific prevalence of and risk factors for metabolic syndrome and its components among 650 adult survivors of childhood leukemia treated without HSCT.[103]
  - The overall prevalence of the condition was 6.9%, with the following age-specific cumulative prevalence:
    - 20 years—1.3%.
    - 25 years—6.1%.
    - 30 years—10.8%.
    - 35 years—22.4%.
  - The prevalence of individual components of the metabolic syndrome was as follows:
    - Increased fasting glucose—5.8%.
    - Increased triglycerides—11.7%.
    - Increased abdominal circumference—16.7%.
    - Decreased HDL cholesterol—26.8%.
    - Increased blood pressure—36.7%.
  - Clinical factors significantly predicting the risk of metabolic syndrome included male sex (OR, 2.64; 95% CI, 1.32–5.29), age at last evaluation (OR, 1.10; 95% CI, 1.04–1.17) and body mass index (BMI) at diagnosis (OR, 1.15; 95% CI, 1.01–1.32), but not cumulative steroid dose. Irradiated and nonirradiated patients exhibited different patterns of metabolic abnormalities, with more frequent abdominal obesity in irradiated patients and more frequent hypertension in nonirradiated patients.
3. A study monitored 784 long-term childhood ALL survivors (median age, 31.7 years) for a median follow-up of 26.1 years.[104]
  - The prevalence of metabolic syndrome was 33.6%, which was significantly higher than that in a cohort of age-, sex-, and race-matched controls (n = 777) from the National Health and Nutrition Examination Survey (RR, 1.43; 95% CI, 1.22–1.69).
  - Risk factors associated with metabolic syndrome in this study included older age and past exposures to cranial radiation therapy.
  - Components of the metabolic syndrome that were significantly more prevalent in ALL survivors than in controls included obesity, insulin resistance, hypertension, and decreased HDL levels.
4. The French childhood leukemia survivors’ cohort showed that the prevalence of metabolic syndrome was increased among childhood leukemia survivors (n = 1,025), relative to controls (n = 3,202).[105]
  - Metabolic syndrome was found in 10.3% of patients (mean follow-up, 16.3 years) and 4.5% of controls (OR, 2.49; P < .001). Transplant patients treated with TBI had the highest risk (OR, 6.26; P < .001). Other treatment groups that also showed a higher risk than controls included patients treated with chemotherapy only. ORs were 1.68 (P = .005) after chemotherapy only, 2.32 (P = .002) after chemotherapy and cranial irradiation, and 2.18 (P = .057) after transplant without irradiation.
  - Compared with controls, unique profiles were seen in survivors according to treatment. Patients who received TBI and developed metabolic syndrome had a smaller waist circumference than controls. In contrast, patients who were treated with cranial irradiation and developed metabolic syndrome had a larger waist circumference than controls. Additionally, TBI recipients had increased triglyceride levels, fasting glucose levels, and systolic blood pressure.
5. In a prospective study of 164 long-term survivors of embryonal tumors treated with abdominal radiation therapy (median follow-up, 26 years), nephroblastoma (OR, 5.2) and neuroblastoma (OR, 6.5) survivors had more components of metabolic syndrome than did controls.[106]
  - Compared with survivors who did not receive radiation therapy, survivors treated with abdominal irradiation had higher blood pressure, triglycerides, low-density lipoprotein cholesterol, and total fat percentage, which were assessed by dual-energy x-ray absorptiometry.

#### Lifestyle impact on modifiable risk factors

- Modifiable risk factors (such as diet, physical activity, and smoking habits) may impact the risk of developing metabolic syndrome in childhood cancer survivors.
- Several studies have provided support for the potential benefits of lifestyle modifications in reducing cardiovascular disease risk.[107-109]

Evidence (lifestyle modifications to reduce cardiovascular risk in childhood cancer survivors):

1. Survivors participating in the SJLIFE study who were adherent to a heart-healthy lifestyle had a lower risk of metabolic syndrome.[107]
  - Females (RR, 2.4; 95% CI, 1.7–3.3) and males (RR, 2.2; 95% CI, 1.6–3.0) in the cohort who did not follow recommended dietary and physical activity guidelines had a more than twofold excess risk of having clinical features of the metabolic syndrome.
2. A CCSS investigation evaluated the impact of exercise on cardiovascular disease risk among survivors of Hodgkin lymphoma.[108]
  - Vigorous exercise was associated with a lower risk of cardiovascular events in a dose-dependent manner, independent of cardiovascular risk profile and treatment.
  - Survivors who were adherent to national vigorous-intensity exercise guidelines had a 51% reduction in the risk of any cardiovascular event compared with those not meeting the guidelines.
3. Another CCSS investigation evaluated the association of exercise with mortality in adult survivors of childhood cancer.[109]
  - After adjusting for chronic health conditions and treatment exposures, all-cause mortality was inversely associated with survivor-reported exercise quartiles (0, 3–6, 9–12, and 15–21 metabolic equivalent task [MET] hours/week).
  - Survivors who endorsed recommended levels of vigorous exercise (≥9 MET hours/week) in early adulthood and those who increased exercise over 8 years had a lower risk of mortality.

#### Abnormal glucose metabolism

For individuals treated at a young age (age <11 years), abdominal radiation therapy and TBI are increasingly recognized as independent risk factors for diabetes mellitus in childhood cancer survivors.[2,110-114]

Evidence (risk factors for diabetes mellitus in childhood cancer survivors):

1. A single-center cohort study of 532 long-term adult survivors (median follow-up, 17.9 years; median age, 25.6 years) observed the following:[111]
  - Treatment, but not genetic variation, was strongly associated with the occurrence of the components of metabolic syndrome.
  - Metabolic syndrome was more frequent in survivors who received cranial (23.3%, P = .002) or abdominal (23.4%, P = .009) radiation therapy than in survivors who did not receive radiation therapy (10.0%).
2. A cross-sectional study evaluated cardiovascular risk factors and insulin resistance in a clinically heterogeneous cohort of 319 childhood cancer survivors 5 or more years since diagnosis and 208 sibling controls.[115]
  - Insulin resistance was significantly higher in survivors treated with cisplatin plus cranial irradiation (92% brain tumors) and in those who received steroids but no cisplatin (most leukemia survivors), compared with siblings.
  - Insulin resistance did not differ between survivors treated with surgery alone and siblings.
  - Among survivors, analysis of individual chemotherapy agents failed to find associations with cardiovascular risk factors or insulin resistance.
  - Compared with siblings, nearly all chemotherapeutic agents, when examined individually, seemed to be associated with a high cardiovascular risk profile, characterized by lower total lean body mass, higher percentage fat mass, and insulin resistance.
3. In a European multicenter cohort of 2,520 childhood cancer survivors (median follow-up, 28 years), significant associations were found between diabetes mellitus and increasing doses of radiation therapy to the tail of the pancreas. This finding supports the contribution of radiation-induced islet cell injury to impairments of glucose homeostasis in this population.[112]
4. A report from the CCSS compared 8,599 childhood cancer survivors with 2,936 randomly selected sibling controls, and adjusted for age, BMI, and several demographic factors.[116]
  - The risk of diabetes mellitus was 1.8 times higher in survivors (95% CI, 1.3–2.5; P < .001).
  - Significant associations were found between diabetes mellitus and young age at diagnosis (0–4 years), the use of alkylating agents, and abdominal radiation therapy or TBI.
  - Survivors exposed to abdominal radiation had a 3.4-fold higher increased risk of diabetes (95% CI, 2.3–5.0; P < .001) when compared with siblings and after adjusting for BMI. Compared with siblings, survivors of neuroblastoma and Wilms tumor who were treated with abdominal radiation therapy had a 6.9-fold and 2.1-fold increased risk of diabetes, respectively. Individuals in these groups who had not been exposed to abdominal radiation therapy were not at increased risk.
  - Survivors were significantly more likely to be receiving medication for hypertension, dyslipidemia, and/or diabetes mellitus than were sibling controls.

Table 12 summarizes metabolic syndrome late effects and the related health screenings.

Table 12. Metabolic Syndrome Late Effects^a^

Predisposing Therapy | Potential Late Effects | Health Screening
Abdominal irradiation; total-body irradiation. | Components of metabolic syndrome (abdominal obesity, hypertension, dyslipidemia, impaired glucose metabolism) | Height, weight, BMI, blood pressure test
Abdominal irradiation; total-body irradiation. | Components of metabolic syndrome (abdominal obesity, hypertension, dyslipidemia, impaired glucose metabolism) | Laboratory tests: Fasting glucose and lipids

BMI = body mass index.

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### Body Composition: Underweight, Overweight, and Obesity

- Childhood cancer survivors are at risk of experiencing abnormal body composition, which includes becoming underweight (BMI, <18.5), becoming overweight (BMI, >25.0 to BMI, <30.0), or being affected by obesity (BMI, ≥30.0).
- BMI at diagnosis has been identified as a significant predictor of being underweight or overweight at follow-up. This finding suggests that genetic or environmental factors contribute to the development or persistence of abnormal body composition.[117,118]

#### Underweight

- Approximately one of ten adult survivors of childhood cancer is underweight. CCSS investigators found that childhood cancer survivors who are underweight have an increased risk of late mortality.[119]
  - Of the 9,454 survivors (median age, 35 years; an average of 17.5 years from diagnosis), 627 (6.6%) were underweight at the baseline survey or at the follow-up questionnaire. Of the 184 deaths, 29 were initially underweight at baseline.
  - Underweight status was more common among females (9.1% vs. 4.5%; P < .01), individuals with lower household incomes (8.9% for <$20,000 vs. 6.0% for >$20,000; P < .01), and those with a history of a serious chronic condition (P = .05). After adjustment for these factors, along with prior smoking status and a history of radiation therapy, underweight survivors had an increased risk of all-cause mortality within 2 years of BMI report (OR, 2.85; P < .01), compared with ideal-weight survivors.
- CCSS investigators identified treatment-related risk factors for being underweight, including TBI (females) or abdominal irradiation (males), use of alkylating agents, and use of anthracyclines.[118]

#### Overweight/obesity

- To date, patients with cancer who have an increased incidence of being affected by overweight and obesity are primarily ALL [117,120-124] and CNS tumor [41,98] survivors who were treated with cranial radiation therapy.[118,125]
- The development of overweight/obesity after cranial radiation therapy is multifactorial and includes the following:[122,126,127]
  - Growth hormone deficiency.
  - Leptin sensitivity.
  - Reduced levels of physical activity and energy expenditure.

Evidence (risk factors for overweight/obesity):

1. In the nationwide Dutch Childhood Cancer Survivor Study (DCCSS-LATER) cohort of adult survivors of childhood cancer (n = 2,338), investigators found that having excess body weight (BMI >2.5 kg/m^2^) occurred in almost one-half of all long-term survivors. This incidence was not increased compared with the general population.[128]
  - Overweight incidence was higher in women aged 50 years and older, and morbid obesity incidence was higher in men aged 50 years and older.
  - Factors such as having excess body weight at cancer diagnosis, receiving cranial irradiation, and having growth hormone deficiency were all associated with long-term overweight status. Corticosteroids were not associated with overweight status.
  - Dual-energy x-ray absorptiometry–based classification identified overweight in an additional 30% of survivors, particularly those treated with abdominal irradiation, TBI, anthracyclines, and platinum chemotherapy.
2. CCSS investigators reported the following independent risk factors for obesity in childhood cancer survivors including treatment, lifestyle, and medication use:[129]
  - Cancer diagnosed at ages 5 to 9 years (RR, 1.12; 95% CI, 1.01–1.24).
  - Abnormal physical functioning (RR, 1.19; 95% CI, 1.06–1.33).
  - Hypothalamic-pituitary radiation dose of 20 Gy to 30 Gy (RR, 1.17; 95% CI, 1.05–1.3; P = .01).
  - Specific antidepressant use of paroxetine (RR, 1.29; 95% CI, 1.08–1.54).
  - Survivors who adhered to the U.S. Centers for Disease Control and Prevention guidelines for vigorous physical activity (RR, 0.90; 95% CI, 0.82–0.97; P = .01) and who had a medium amount of anxiety (RR, 0.86; 95% CI, 0.75–0.99; P = .04) had a lower risk of obesity.[129]

#### Body composition alterations after childhood ALL

Evidence (risk factors for body composition alterations):

1. Moderate-dose cranial radiation therapy (18–24 Gy) among ALL survivors is associated with obesity, particularly in females treated at a young age.[120,122,130]
  - Female adult survivors of childhood ALL who were treated with cranial radiation therapy of 24 Gy before age 5 years are four times more likely to be affected by obesity than are women who have not been treated for a cancer.[120]
  - Women treated with 18 Gy to 24 Gy cranial radiation therapy before age 10 years have a substantially greater rate of increase in their BMI through their young adult years than do women who were treated for ALL with only chemotherapy or women in the general population.[122]
  - These women also have a significantly increased visceral adiposity and associated insulin resistance.[131,132]
2. Body composition alterations appear to be attenuated in males.
  - A study of long-term male survivors of ALL (mean age, 29 years) observed significantly higher body adiposity than in age-matched controls, despite normal weight and BMI.[133]
  - Potential indicators of increased adiposity included high leptin and low sex hormone–binding globulin levels.[133]
  - Serum testicular endocrine markers (testosterone, FSH, or inhibin B) did not correlate with body adiposity.[133]
3. ALL therapy regimens are associated with increases in BMI shortly after completion of therapy, and possibly with a higher risk of obesity in the long term.[123,124,134-136]
  - Several studies have reported that survivors of childhood ALL treated with chemotherapy alone also exhibit long-term changes in body composition, with relative increases in body fat [132,137-139] and visceral adiposity in comparison to lean mass.[131]
  - These changes cannot be detected if BMI alone is used in the assessment of metabolic risk in this population.
4. A genetic predisposition to excess adiposity may be enhanced when a child with ALL is treated with cranial irradiation. Genetic determinants of BMI identified in the general population were investigated in two large cohorts of childhood cancer survivors (n = 1,458) (CCSS and SJLIFE study).[140]
  - Among ALL survivors who were treated with cranial radiation therapy in childhood, investigators identified statistical interactions of cranial radiation therapy treatment in survivors with germline genetic variants known to affect the baseline genetic risk of adiposity. This suggests that a genetic predisposition to excess adiposity may be enhanced when an individual is treated with cranial radiation therapy for childhood ALL.

Evidence (body composition changes in adult survivors of childhood ALL):

1. A cohort study of 365 adult survivors of ALL (149 treated with cranial radiation therapy and 216 treated without cranial radiation therapy) compared body composition, energy balance, and fitness with age-, sex-, and race-matched peers.[141]
  - Female survivors who were not exposed to cranial irradiation had comparable body composition values to that of peers.
  - Waist circumference, waist-to-height ratio, total fat mass, and percent fat mass were higher among male survivors and cranial radiation–exposed female survivors than among comparison group members.
  - Survivors of both sexes exposed to cranial radiation therapy had higher BMI and percent body fat than did survivors not exposed to cranial radiation therapy.
  - Although survivors who did not receive cranial radiation therapy had energy balances similar to the matched peer group, they had significantly higher measures of impaired fitness (impaired flexibility, peripheral sensorimotor deficits, proximal muscle weakness, and poor exercise tolerance).
2. In a CCSS study that was based on self-reported height and weight measurements, the following was observed:
  - Adult survivors of childhood ALL treated with chemotherapy alone did not have significantly higher rates of obesity than sibling controls.[120]
  - There were also no differences in BMI changes between these groups after a subsequent period of follow-up that averaged 7.8 years.[122]
3. Swiss investigators evaluated self-reported weight in 1,936 adult survivors of childhood ALL, non-Hodgkin lymphoma, and Hodgkin lymphoma (median age, 24 years; median time from diagnosis, 17 years) and compared them with siblings and the general population.[142]
  - The proportion of survivors who reported being overweight (26%) was comparable to that of siblings (24%) and the general Swiss population (25%).
  - There was no evidence of a relationship between cumulative glucocorticoid dose and being overweight.
  - There was also no evidence that the use of cranial radiation therapy modified the effect of the cumulative glucocorticoid dose on being overweight.

Variable outcomes across studies likely relate to the use of BMI as the metric for abnormal body composition, which does not adequately assess visceral adiposity that can contribute to metabolic risk in this population.[143]

#### Body composition alterations after treatment for CNS tumors

Among brain tumor survivors treated with higher doses of cranial radiation therapy, the highest risk of developing obesity has been observed in females treated at a younger age.[144]

Survivors of craniopharyngioma have a substantially increased risk of developing extreme obesity because of the tumor location and the hypothalamic damage resulting from surgical resection.[145-148]

A cohort of 661 childhood survivors of brain tumors (mean follow-up time, 7.3 years) was evaluated for weight gain associated with hypothalamic-pituitary dysfunction. This cohort excluded survivors who had craniopharyngiomas or pituitary tumors.[149]

- Among survivors between the ages of 4 and 20 years at follow-up, 20.3% were classified as overweight and 8.5% had obesity, compared with 10.5% and 2.7%, respectively, in the general Dutch population of comparable age.
- Hypothalamic-pituitary dysfunction was more prevalent in survivors who are overweight or have obesity than in survivors of normal weight.
- BMI SDS at diagnosis, diagnosis of low-grade glioma, and history of diabetes insipidus and central precocious puberty were associated with weight gain, being overweight, or having obesity.

#### Body composition alterations after HSCT

- Survivors of childhood cancer treated with TBI in preparation for an allogeneic HSCT have increased measures of body fatness (percent fat) while often having a normal BMI.[113,150-152]
- Longitudinal decline in BMI related to substantial decrease in lean mass has been observed among survivors of hematological malignancies treated with allogeneic HSCT.[153]
- This finding was largely attributable to TBI conditioning and severity of chronic GVHD.[153]

#### Body composition alterations after solid malignancies

- Survivors of abdominal and pelvic solid tumors treated with radiation therapy are at risk of alterations in body composition and metabolic health that can adversely affect functional performance.
- Among 431 survivors of childhood abdominal or pelvic tumors (median attained age, 29.9 years), higher cumulative doses of abdominal and pelvic radiation therapy were associated with lower lean muscle mass in both males and females.[154]
- Compared with survivors who have normal (high) lean mass and normal (low) fat mass, survivors with normal lean mass and high fat mass had a significantly higher risk of insulin resistance, low HDL cholesterol, reduced quadriceps strength, and reduced distance covered in a 6-minute walk.[154]

#### Body composition and frailty

Young adult survivors of childhood cancer have a higher-than-expected prevalence of frailty, a phenotype characterized by low muscle mass, self-reported exhaustion, low energy expenditure, slow walking speed, and weakness.[155]

- Individuals are considered prefrail if they have two of these five characteristics and frail if they have three or more of these characteristics.[155]
- The frailty phenotype increases in prevalence with aging, and has been associated with excess risk of mortality and onset of chronic conditions.[155]
- In CCSS participants, the overall prevalence of frailty among survivors (6.4%) was three times higher than that of sibling controls (2.2%).[156]
  - The highest prevalence of frailty was reported in survivors of CNS tumors (9.5%) and bone tumors (8.1%).
  - Cranial radiation, pelvic radiation (≥34 Gy), and lung surgery were independent risk factors for frailty in the CCSS cohort.
- In SJLIFE study participants (median age at study entry, 30 years), frailty prevalence increased from 6.2% to 13.6% during the 5 years of follow-up.[157]
  - Risk factors for frailty at follow-up included treatment with chest radiation therapy of 20 Gy or higher (OR, 1.98), cardiac (OR, 1.58) and neurological (OR, 2.58) conditions, lack of strength training (OR, 1.74), sedentary lifestyle (OR, 1.75), and frailty at study entry (OR, 11.12).
  - Prior history of frailty was the strongest risk factor for death during follow-up (OR, 3.52).
- In an SJLIFE study (follow-up interval, 5 years), young-adult survivors of childhood cancer who are considered prefrail and frail (n = 205) experienced significant declines in neurocognitive domains commonly associated with dementia and Alzheimer disease.[158]
  - Survivors considered frail declined more on tests of short-term verbal recall and executive function than did survivors not considered frail.
  - Survivors considered frail and prefrail experienced greater declines in focused attention than did survivors not considered frail.
- The prevalence of and risk factors for prefrailty, frailty, and sarcopenia were evaluated in a DCCSS-LATER cross-sectional study of adult survivors (mean age, 33.1 years at participation) of childhood cancer who were treated between 1963 and 2001.[159]
  - The prefrailty rate was 20.3%, the frailty rate was 7.4%, and the sarcopenia rate was 4.4%.
  - Significant risk factors for prefrailty included the following:
    - Being underweight (OR, 3.38; 95% CI, 1.92–5.95).
    - Having obesity (OR, 1.67; 95% CI, 1.14–2.43).
    - Exposure to cranial irradiation (OR, 2.07; 95% CI, 1.47–2.93).
    - Exposure to TBI (OR, 3.17; 95% CI, 1.77–5.70).
    - Exposure to cisplatin dose of at least 600 mg/m^2^ (OR, 3.75; 95% CI, 1.82–7.74).
    - Having a growth hormone deficiency (OR, 2.25; 95% CI, 1.23–4.09).
    - Having hyperthyroidism (OR, 3.72; 95% CI, 1.63–8.47).
    - Low bone mineral density (OR for Z score ≤−1 and >-2, 1.80; 95% CI, 1.31–2.47 and OR for Z score ≤-2, 3.37; 95% CI, 2.20–5.15).
    - Having a folic acid deficiency (OR, 1.87; 95% CI, 1.31–2.68).
  - Significant risk factors for sarcopenia included the following:
    - Male sex (OR, 4.56; 95% CI, 2.26–9.17).
    - Having a lower BMI (continuous, OR, 0.52; 95% CI, 0.45–0.60).
    - Exposure to cranial irradiation (OR, 3.87; 95% CI, 1.80–8.31).
    - Exposure to TBI (OR, 4.52; 95% CI, 1.67–12.20).
    - Having hypogonadism (OR, 3.96; 95% CI, 1.40–11.18).
    - Having a growth hormone deficiency (OR, 4.66; 95% CI, 1.44–15.15).
    - Having a vitamin B12 deficiency (OR, 6.26).
- Survivors of childhood cancer may experience accelerated biological aging, resulting in premature frailty and death. Investigators used the SJLIFE cohort to evaluate a panel of the best-evidenced and most-studied of the newest aging biomarkers. They included seven measures of biological age acceleration in their analysis. Adult survivors of childhood cancer from the SJLIFE cohort were compared with two other control groups (community controls and the National Health and Nutrition Examination Survey controls). The goal was to determine whether survivors of childhood cancer (n = 4,117) were biologically older and aging more rapidly than controls who have not had childhood cancer.[160]
  - Survivors of cancer aged 5% faster per year and measured, on average, 0.6 to 6.44 years biologically older than community controls.
  - Survivors were 5 to 16 years biologically older than expected, compared with adults of their chronological age at the population level.
  - Survivors who were treated with HSCT and vinca alkaloid chemotherapy showed the fastest trajectories of biological aging.
  - Biologically older and faster-aging survivors consistently and robustly had a higher risk of frailty and died earlier than those with slower biological aging.
- Ongoing research aims to elucidate the pathophysiology of frailty and develop/test interventions to prevent or reverse this condition.

Table 13 summarizes body composition late effects and the related health screenings.

Table 13. Body Composition Late Effects^a^

Predisposing Therapy | Potential Late Effects | Health Screening
Cranial radiation therapy | Overweight/obesity | Height, weight, BMI, blood pressure test
Cranial radiation therapy | Overweight/obesity | Laboratory tests: Fasting glucose and lipids

BMI = body mass index.

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

For endocrine and metabolic syndrome late effects information, including risk factors, evaluation, and health counseling, see the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### References

Brignardello E, Felicetti F, Castiglione A, et al.: Endocrine health conditions in adult survivors of childhood cancer: the need for specialized adult-focused follow-up clinics. Eur J Endocrinol 168 (3): 465-72, 2013.23258270
Mostoufi-Moab S, Seidel K, Leisenring WM, et al.: Endocrine Abnormalities in Aging Survivors of Childhood Cancer: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 34 (27): 3240-7, 2016.27382091
Clement SC, Schouten-van Meeteren AY, Boot AM, et al.: Prevalence and Risk Factors of Early Endocrine Disorders in Childhood Brain Tumor Survivors: A Nationwide, Multicenter Study. J Clin Oncol 34 (36): 4362-4370, 2016.27998218
Chemaitilly W, Li Z, Huang S, et al.: Anterior hypopituitarism in adult survivors of childhood cancers treated with cranial radiotherapy: a report from the St Jude Lifetime Cohort study. J Clin Oncol 33 (5): 492-500, 2015.25559807
González Briceño LG, Kariyawasam D, Samara-Boustani D, et al.: High Prevalence of Early Endocrine Disorders After Childhood Brain Tumors in a Large Cohort. J Clin Endocrinol Metab 107 (5): e2156-e2166, 2022.34918112
Clement SC, van Rijn RR, van Eck-Smit BL, et al.: Long-term efficacy of current thyroid prophylaxis and future perspectives on thyroid protection during 131I-metaiodobenzylguanidine treatment in children with neuroblastoma. Eur J Nucl Med Mol Imaging 42 (5): 706-15, 2015.25512056
Clement SC, van Eck-Smit BL, van Trotsenburg AS, et al.: Long-term follow-up of the thyroid gland after treatment with 131I-Metaiodobenzylguanidine in children with neuroblastoma: importance of continuous surveillance. Pediatr Blood Cancer 60 (11): 1833-8, 2013.23832530
Bombardieri E, Giammarile F, Aktolun C, et al.: 131I/123I-metaiodobenzylguanidine (mIBG) scintigraphy: procedure guidelines for tumour imaging. Eur J Nucl Med Mol Imaging 37 (12): 2436-46, 2010.20644928
Sharp SE, Trout AT, Weiss BD, et al.: MIBG in Neuroblastoma Diagnostic Imaging and Therapy. Radiographics 36 (1): 258-78, 2016 Jan-Feb.26761540
Clement SC, Tytgat GAM, van Trotsenburg ASP, et al.: Thyroid function after diagnostic 123I-metaiodobenzylguanidine in children with neuroblastic tumors. Ann Nucl Med 36 (6): 579-585, 2022.35499668
Verloop H, Louwerens M, Schoones JW, et al.: Risk of hypothyroidism following hemithyroidectomy: systematic review and meta-analysis of prognostic studies. J Clin Endocrinol Metab 97 (7): 2243-55, 2012.22511795
Zatelli MC, Lamartina L, Meringolo D, et al.: Thyroid nodule recurrence following lobo-isthmectomy: incidence, patient's characteristics, and risk factors. J Endocrinol Invest 41 (12): 1469-1475, 2018.30182360
Chemaitilly W, Li Z, Brinkman TM, et al.: Primary hypothyroidism in childhood cancer survivors: Prevalence, risk factors, and long-term consequences. Cancer 128 (3): 606-614, 2022.34643950
Bölling T, Geisenheiser A, Pape H, et al.: Hypothyroidism after head-and-neck radiotherapy in children and adolescents: preliminary results of the "Registry for the Evaluation of Side Effects After Radiotherapy in Childhood and Adolescence" (RiSK). Int J Radiat Oncol Biol Phys 81 (5): e787-91, 2011.21167655
Inskip PD, Veiga LHS, Brenner AV, et al.: Hypothyroidism after Radiation Therapy for Childhood Cancer: A Report from the Childhood Cancer Survivor Study. Radiat Res 190 (2): 117-132, 2018.29763379
Sklar C, Whitton J, Mertens A, et al.: Abnormalities of the thyroid in survivors of Hodgkin's disease: data from the Childhood Cancer Survivor Study. J Clin Endocrinol Metab 85 (9): 3227-32, 2000.10999813 20452442
Vatner RE, Niemierko A, Misra M, et al.: Endocrine Deficiency As a Function of Radiation Dose to the Hypothalamus and Pituitary in Pediatric and Young Adult Patients With Brain Tumors. J Clin Oncol 36 (28): 2854-2862, 2018.30118397
Aldrich KD, Horne VE, Bielamowicz K, et al.: Comparison of hypothyroidism, growth hormone deficiency, and adrenal insufficiency following proton and photon radiotherapy in children with medulloblastoma. J Neurooncol 155 (1): 93-100, 2021.34596831
Milano MT, Vargo JA, Yorke ED, et al.: Primary Hypothyroidism in Childhood Cancer Survivors Treated With Radiation Therapy: A PENTEC Comprehensive Review. Int J Radiat Oncol Biol Phys 119 (2): 482-493, 2024.33810948
Wheeler G, Grassberger C, Samers J, et al.: Central Endocrine Complications Among Childhood Cancer Survivors Treated With Radiation Therapy: A PENTEC Comprehensive Review. Int J Radiat Oncol Biol Phys 119 (2): 457-466, 2024.37269265
Gleeson HK, Darzy K, Shalet SM: Late endocrine, metabolic and skeletal sequelae following treatment of childhood cancer. Best Pract Res Clin Endocrinol Metab 16 (2): 335-48, 2002.12064896 22060279
Inskip PD, Veiga LHS, Brenner AV, et al.: Hyperthyroidism After Radiation Therapy for Childhood Cancer: A Report from the Childhood Cancer Survivor Study. Int J Radiat Oncol Biol Phys 104 (2): 415-424, 2019.30769174
Clausen CT, Hasle H, Holmqvist AS, et al.: Hyperthyroidism as a late effect in childhood cancer survivors - an Adult Life after Childhood Cancer in Scandinavia (ALiCCS) study. Acta Oncol 58 (2): 227-231, 2019.30585514
Bhatti P, Veiga LH, Ronckers CM, et al.: Risk of second primary thyroid cancer after radiotherapy for a childhood cancer in a large cohort study: an update from the childhood cancer survivor study. Radiat Res 174 (6): 741-52, 2010.21128798
Haddy N, El-Fayech C, Guibout C, et al.: Thyroid adenomas after solid cancer in childhood. Int J Radiat Oncol Biol Phys 84 (2): e209-15, 2012.22672756
Ronckers CM, Sigurdson AJ, Stovall M, et al.: Thyroid cancer in childhood cancer survivors: a detailed evaluation of radiation dose response and its modifiers. Radiat Res 166 (4): 618-28, 2006.17007558
Sigurdson AJ, Ronckers CM, Mertens AC, et al.: Primary thyroid cancer after a first tumour in childhood (the Childhood Cancer Survivor Study): a nested case-control study. Lancet 365 (9476): 2014-23, 2005 Jun 11-17.15950715
van Santen HM, Tytgat GA, van de Wetering MD, et al.: Differentiated thyroid carcinoma after 131I-MIBG treatment for neuroblastoma during childhood: description of the first two cases. Thyroid 22 (6): 643-6, 2012.22524499
Veiga LH, Lubin JH, Anderson H, et al.: A pooled analysis of thyroid cancer incidence following radiotherapy for childhood cancer. Radiat Res 178 (4): 365-76, 2012.22857014
Kovalchik SA, Ronckers CM, Veiga LH, et al.: Absolute risk prediction of second primary thyroid cancer among 5-year survivors of childhood cancer. J Clin Oncol 31 (1): 119-27, 2013.23169509
Vivanco M, Dalle JH, Alberti C, et al.: Malignant and benign thyroid nodules after total body irradiation preceding hematopoietic cell transplantation during childhood. Eur J Endocrinol 167 (2): 225-33, 2012.22619350
Li Z, Franklin J, Zelcer S, et al.: Ultrasound surveillance for thyroid malignancies in survivors of childhood cancer following radiotherapy: a single institutional experience. Thyroid 24 (12): 1796-805, 2014.25286003
Brignardello E, Felicetti F, Castiglione A, et al.: Ultrasound surveillance for radiation-induced thyroid carcinoma in adult survivors of childhood cancer. Eur J Cancer 55: 74-80, 2016.26775213
Clement SC, Kremer LCM, Verburg FA, et al.: Balancing the benefits and harms of thyroid cancer surveillance in survivors of Childhood, adolescent and young adult cancer: Recommendations from the international Late Effects of Childhood Cancer Guideline Harmonization Group in collaboration with the PanCareSurFup Consortium. Cancer Treat Rev 63: 28-39, 2018.29202445
Baran JA, Halada S, Bauer AJ, et al.: Thyroid Ultrasound Screening in Childhood Cancer Survivors following Radiotherapy. Horm Res Paediatr 97 (3): 243-253, 2024.37722360
Metzger ML, Howard SC, Hudson MM, et al.: Natural history of thyroid nodules in survivors of pediatric Hodgkin lymphoma. Pediatr Blood Cancer 46 (3): 314-9, 2006.16086425
Francis GL, Waguespack SG, Bauer AJ, et al.: Management Guidelines for Children with Thyroid Nodules and Differentiated Thyroid Cancer. Thyroid 25 (7): 716-59, 2015.25900731
Sanders JE, Hoffmeister PA, Woolfrey AE, et al.: Thyroid function following hematopoietic cell transplantation in children: 30 years' experience. Blood 113 (2): 306-8, 2009.18838614
Cattoni A, Molinari S, Gaiero A, et al.: Thyroid Disorders Following Hematopoietic Stem Cell Transplantation in Childhood: Impact of Conditioning Regimen on Thyroid Dysfunction, Volume Changes, and Occurrence of Nodules. Transplant Cell Ther 28 (8): 506.e1-506.e12, 2022.35660063
van Iersel L, Mulder RL, Denzer C, et al.: Hypothalamic-Pituitary and Other Endocrine Surveillance Among Childhood Cancer Survivors. Endocr Rev 43 (5): 794-823, 2022.34962573
Gurney JG, Kadan-Lottick NS, Packer RJ, et al.: Endocrine and cardiovascular late effects among adult survivors of childhood brain tumors: Childhood Cancer Survivor Study. Cancer 97 (3): 663-73, 2003.12548609 22434840
Hudson MM, Ness KK, Gurney JG, et al.: Clinical ascertainment of health outcomes among adults treated for childhood cancer. JAMA 309 (22): 2371-81, 2013.23757085
Sklar CA, Antal Z, Chemaitilly W, et al.: Hypothalamic-Pituitary and Growth Disorders in Survivors of Childhood Cancer: An Endocrine Society Clinical Practice Guideline. J Clin Endocrinol Metab 103 (8): 2761-2784, 2018.29982476
Ramelli GP, von der Weid N, Stanga Z, et al.: Suprasellar germinomas in childhood and adolescence: diagnostic pitfalls. J Pediatr Endocrinol Metab 11 (6): 693-7, 1998 Nov-Dec.9829222
Vinchon M, Baroncini M, Leblond P, et al.: Morbidity and tumor-related mortality among adult survivors of pediatric brain tumors: a review. Childs Nerv Syst 27 (5): 697-704, 2011.21409425
Fahrner B, Prosch H, Minkov M, et al.: Long-term outcome of hypothalamic pituitary tumors in Langerhans cell histiocytosis. Pediatr Blood Cancer 58 (4): 606-10, 2012.22183971
Lawson SA, Horne VE, Golekoh MC, et al.: Hypothalamic-pituitary function following childhood brain tumors: Analysis of prospective annual endocrine screening. Pediatr Blood Cancer 66 (5): e27631, 2019.30693650
Lebbink CA, Ringers TP, Schouten-van Meeteren AYN, et al.: Prevalence and risk factors of hypothalamic-pituitary dysfunction in infant and toddler childhood brain tumor survivors. Eur J Endocrinol 185 (4): 597-606, 2021.34324432
Fraser O, Crowne E, Tacey M, et al.: Correlating measured radiotherapy dose with patterns of endocrinopathy: The importance of minimizing pituitary dose. Pediatr Blood Cancer 69 (11): e29847, 2022.35713216
van Iersel L, Li Z, Srivastava DK, et al.: Hypothalamic-Pituitary Disorders in Childhood Cancer Survivors: Prevalence, Risk Factors and Long-Term Health Outcomes. J Clin Endocrinol Metab 104 (12): 6101-6115, 2019.31373627
Darzy KH, Shalet SM: Hypopituitarism following radiotherapy. Pituitary 12 (1): 40-50, 2009.18270844
Viana MB, Vilela MI: Height deficit during and many years after treatment for acute lymphoblastic leukemia in children: a review. Pediatr Blood Cancer 50 (2 Suppl): 509-16; discussion 517, 2008.18064646
Merchant TE, Goloubeva O, Pritchard DL, et al.: Radiation dose-volume effects on growth hormone secretion. Int J Radiat Oncol Biol Phys 52 (5): 1264-70, 2002.11955738 21952998
Merchant TE, Rose SR, Bosley C, et al.: Growth hormone secretion after conformal radiation therapy in pediatric patients with localized brain tumors. J Clin Oncol 29 (36): 4776-80, 2011.22042949
Merchant TE, Wu S, Onar-Thomas A, et al.: Endocrinopathy After Treatment for Medulloblastoma: Results From the SJMB03 Trial of Risk-Adapted Radiation Therapy. Int J Radiat Oncol Biol Phys 116 (3): 560-568, 2023.36563909
van Iersel L, van Santen HM, Potter B, et al.: Clinical impact of hypothalamic-pituitary disorders after conformal radiation therapy for pediatric low-grade glioma or ependymoma. Pediatr Blood Cancer 67 (12): e28723, 2020.33037871
Sklar C, Mertens A, Walter A, et al.: Final height after treatment for childhood acute lymphoblastic leukemia: comparison of no cranial irradiation with 1800 and 2400 centigrays of cranial irradiation. J Pediatr 123 (1): 59-64, 1993.8320626 93308602
Chow EJ, Friedman DL, Yasui Y, et al.: Decreased adult height in survivors of childhood acute lymphoblastic leukemia: a report from the Childhood Cancer Survivor Study. J Pediatr 150 (4): 370-5, 375.e1, 2007.17382112
Vandecruys E, Dhooge C, Craen M, et al.: Longitudinal linear growth and final height is impaired in childhood acute lymphoblastic leukemia survivors after treatment without cranial irradiation. J Pediatr 163 (1): 268-73, 2013.23351599
Browne EK, Zhou Y, Chemaitilly W, et al.: Changes in body mass index, height, and weight in children during and after therapy for acute lymphoblastic leukemia. Cancer 124 (21): 4248-4259, 2018.30358906
Demoor-Goldschmidt C, Allodji RS, Journy N, et al.: Risk Factors for Small Adult Height in Childhood Cancer Survivors. J Clin Oncol 38 (16): 1785-1796, 2020.32196392
Mizumoto M, Oshiro Y, Pan H, et al.: Height after photon craniospinal irradiation in pediatric patients treated for central nervous system embryonal tumors. Pediatr Blood Cancer 67 (10): e28617, 2020.32715632
Ogilvy-Stuart AL, Clark DJ, Wallace WH, et al.: Endocrine deficit after fractionated total body irradiation. Arch Dis Child 67 (9): 1107-10, 1992.1417055 93037583
Willi SM, Cooke K, Goldwein J, et al.: Growth in children after bone marrow transplantation for advanced neuroblastoma compared with growth after transplantation for leukemia or aplastic anemia. J Pediatr 120 (5): 726-32, 1992.1578307 92251513
Wingard JR, Plotnick LP, Freemer CS, et al.: Growth in children after bone marrow transplantation: busulfan plus cyclophosphamide versus cyclophosphamide plus total body irradiation. Blood 79 (4): 1068-73, 1992.1737091 92144978
Huma Z, Boulad F, Black P, et al.: Growth in children after bone marrow transplantation for acute leukemia. Blood 86 (2): 819-24, 1995.7606013 95329743
Bernard F, Bordigoni P, Simeoni MC, et al.: Height growth during adolescence and final height after haematopoietic SCT for childhood acute leukaemia: the impact of a conditioning regimen with BU or TBI. Bone Marrow Transplant 43 (8): 637-42, 2009.19011662
Chemaitilly W, Sklar CA: Endocrine complications of hematopoietic stem cell transplantation. Endocrinol Metab Clin North Am 36 (4): 983-98; ix, 2007.17983932
Socié G, Salooja N, Cohen A, et al.: Nonmalignant late effects after allogeneic stem cell transplantation. Blood 101 (9): 3373-85, 2003.12511420 22592436
Cohen A, Rovelli A, Bakker B, et al.: Final height of patients who underwent bone marrow transplantation for hematological disorders during childhood: a study by the Working Party for Late Effects-EBMT. Blood 93 (12): 4109-15, 1999.10361107 99290764
Brennan BM, Shalet SM: Endocrine late effects after bone marrow transplant. Br J Haematol 118 (1): 58-66, 2002.12100128
Sfeir JG, Kittah NEN, Tamhane SU, et al.: Diagnosis of GH Deficiency as a Late Effect of Radiotherapy in Survivors of Childhood Cancers. J Clin Endocrinol Metab 103 (8): 2785-2793, 2018.29982753
Raman S, Grimberg A, Waguespack SG, et al.: Risk of Neoplasia in Pediatric Patients Receiving Growth Hormone Therapy--A Report From the Pediatric Endocrine Society Drug and Therapeutics Committee. J Clin Endocrinol Metab 100 (6): 2192-203, 2015.25839904
Chemaitilly W, Robison LL: Safety of growth hormone treatment in patients previously treated for cancer. Endocrinol Metab Clin North Am 41 (4): 785-92, 2012.23099270
Sklar CA, Mertens AC, Mitby P, et al.: Risk of disease recurrence and second neoplasms in survivors of childhood cancer treated with growth hormone: a report from the Childhood Cancer Survivor Study. J Clin Endocrinol Metab 87 (7): 3136-41, 2002.12107213 22103229
Ergun-Longmire B, Mertens AC, Mitby P, et al.: Growth hormone treatment and risk of second neoplasms in the childhood cancer survivor. J Clin Endocrinol Metab 91 (9): 3494-8, 2006.16822820
Patterson BC, Chen Y, Sklar CA, et al.: Growth hormone exposure as a risk factor for the development of subsequent neoplasms of the central nervous system: a report from the childhood cancer survivor study. J Clin Endocrinol Metab 99 (6): 2030-7, 2014.24606096
Bogarin R, Steinbok P: Growth hormone treatment and risk of recurrence or progression of brain tumors in children: a review. Childs Nerv Syst 25 (3): 273-9, 2009.19142625
Tamhane S, Sfeir JG, Kittah NEN, et al.: GH Therapy in Childhood Cancer Survivors: A Systematic Review and Meta-Analysis. J Clin Endocrinol Metab 103 (8): 2794-2801, 2018.29982555
Thomas-Teinturier C, Oliver-Petit I, Pacquement H, et al.: Influence of growth hormone therapy on the occurrence of a second neoplasm in survivors of childhood cancer. Eur J Endocrinol 183 (4): 471-480, 2020.32738133
Boguszewski MCS, Boguszewski CL, Chemaitilly W, et al.: Safety of growth hormone replacement in survivors of cancer and intracranial and pituitary tumours: a consensus statement. Eur J Endocrinol 186 (6): P35-P52, 2022.35319491
Chemaitilly W, Merchant TE, Li Z, et al.: Central precocious puberty following the diagnosis and treatment of paediatric cancer and central nervous system tumours: presentation and long-term outcomes. Clin Endocrinol (Oxf) 84 (3): 361-71, 2016.26464129
Armstrong GT, Whitton JA, Gajjar A, et al.: Abnormal timing of menarche in survivors of central nervous system tumors: A report from the Childhood Cancer Survivor Study. Cancer 115 (11): 2562-70, 2009.19309737
Didcock E, Davies HA, Didi M, et al.: Pubertal growth in young adult survivors of childhood leukemia. J Clin Oncol 13 (10): 2503-7, 1995.7595700 96007573
Shalet SM, Crowne EC, Didi MA, et al.: Irradiation-induced growth failure. Baillieres Clin Endocrinol Metab 6 (3): 513-26, 1992.1524549 92398624
Gan HW, Phipps K, Aquilina K, et al.: Neuroendocrine Morbidity After Pediatric Optic Gliomas: A Longitudinal Analysis of 166 Children Over 30 Years. J Clin Endocrinol Metab 100 (10): 3787-99, 2015.26218754
Chemaitilly W, Sklar CA: Endocrine complications in long-term survivors of childhood cancers. Endocr Relat Cancer 17 (3): R141-59, 2010.20453080
Greulich WW, Pyle SI: Radiographic Atlas of Skeletal Development of Hand and Wrist. 2nd ed. Stanford University Press, 1959.
Gleeson HK, Stoeter R, Ogilvy-Stuart AL, et al.: Improvements in final height over 25 years in growth hormone (GH)-deficient childhood survivors of brain tumors receiving GH replacement. J Clin Endocrinol Metab 88 (8): 3682-9, 2003.12915655
Laughton SJ, Merchant TE, Sklar CA, et al.: Endocrine outcomes for children with embryonal brain tumors after risk-adapted craniospinal and conformal primary-site irradiation and high-dose chemotherapy with stem-cell rescue on the SJMB-96 trial. J Clin Oncol 26 (7): 1112-8, 2008.18309946
Bielamowicz K, Okcu MF, Sonabend R, et al.: Hypothyroidism after craniospinal irradiation with proton or photon therapy in patients with medulloblastoma. Pediatr Hematol Oncol 35 (4): 257-267, 2018.30537887
van Iersel L, Xu J, Potter BS, et al.: Clinical Importance of Free Thyroxine Concentration Decline After Radiotherapy for Pediatric and Adolescent Brain Tumors. J Clin Endocrinol Metab 104 (11): 4998-5007, 2019.31173083
Kazlauskaite R, Evans AT, Villabona CV, et al.: Corticotropin tests for hypothalamic-pituitary- adrenal insufficiency: a metaanalysis. J Clin Endocrinol Metab 93 (11): 4245-53, 2008.18697868
Rose SR, Danish RK, Kearney NS, et al.: ACTH deficiency in childhood cancer survivors. Pediatr Blood Cancer 45 (6): 808-13, 2005.15700255
Clement SC, Peeters RP, Ronckers CM, et al.: Intermediate and long-term adverse effects of radioiodine therapy for differentiated thyroid carcinoma--a systematic review. Cancer Treat Rev 41 (10): 925-34, 2015.26421813
Follin C, Erfurth EM: Long-Term Effect of Cranial Radiotherapy on Pituitary-Hypothalamus Area in Childhood Acute Lymphoblastic Leukemia Survivors. Curr Treat Options Oncol 17 (9): 50, 2016.27476159
Rensen N, Gemke RJ, van Dalen EC, et al.: Hypothalamic-pituitary-adrenal (HPA) axis suppression after treatment with glucocorticoid therapy for childhood acute lymphoblastic leukaemia. Cochrane Database Syst Rev 11 (11): CD008727, 2017.29106702
Constine LS, Woolf PD, Cann D, et al.: Hypothalamic-pituitary dysfunction after radiation for brain tumors. N Engl J Med 328 (2): 87-94, 1993.8416438 93101177
Constine LS, Rubin P, Woolf PD, et al.: Hyperprolactinemia and hypothyroidism following cytotoxic therapy for central nervous system malignancies. J Clin Oncol 5 (11): 1841-51, 1987.3681371 88061494
Melmed S, Casanueva FF, Hoffman AR, et al.: Diagnosis and treatment of hyperprolactinemia: an Endocrine Society clinical practice guideline. J Clin Endocrinol Metab 96 (2): 273-88, 2011.21296991
National Cholesterol Education Program (NCEP) Expert Panel on Detection, Evaluation, and Treatment of High Blood Cholesterol in Adults (Adult Treatment Panel III): Third Report of the National Cholesterol Education Program (NCEP) Expert Panel on Detection, Evaluation, and Treatment of High Blood Cholesterol in Adults (Adult Treatment Panel III) final report. Circulation 106 (25): 3143-421, 2002.12485966
Bolier M, de Winter DTC, Pluimakers VG, et al.: Prevalence and determinants of metabolic syndrome in 2338 childhood cancer survivors: A Dutch Childhood Cancer Survivor LATER 2 study. Cancer 131 (1): e35681, 2025.39748458
Saultier P, Auquier P, Bertrand Y, et al.: Metabolic syndrome in long-term survivors of childhood acute leukemia treated without hematopoietic stem cell transplantation: an L.E.A. study. Haematologica 101 (12): 1603-1610, 2016.27515247
Nottage KA, Ness KK, Li C, et al.: Metabolic syndrome and cardiovascular risk among long-term survivors of acute lymphoblastic leukaemia - From the St. Jude Lifetime Cohort. Br J Haematol 165 (3): 364-74, 2014.24467690
Oudin C, Berbis J, Bertrand Y, et al.: Prevalence and characteristics of metabolic syndrome in adults from the French childhood leukemia survivors' cohort: a comparison with controls from the French population. Haematologica 103 (4): 645-654, 2018.29351982
van Waas M, Neggers SJ, Raat H, et al.: Abdominal radiotherapy: a major determinant of metabolic syndrome in nephroblastoma and neuroblastoma survivors. PLoS One 7 (12): e52237, 2012.23251703
Smith WA, Li C, Nottage KA, et al.: Lifestyle and metabolic syndrome in adult survivors of childhood cancer: a report from the St. Jude Lifetime Cohort Study. Cancer 120 (17): 2742-50, 2014.25070001
Jones LW, Liu Q, Armstrong GT, et al.: Exercise and risk of major cardiovascular events in adult survivors of childhood hodgkin lymphoma: a report from the childhood cancer survivor study. J Clin Oncol 32 (32): 3643-50, 2014.25311213
Scott JM, Li N, Liu Q, et al.: Association of Exercise With Mortality in Adult Survivors of Childhood Cancer. JAMA Oncol 4 (10): 1352-1358, 2018.29862412
Baker KS, Ness KK, Steinberger J, et al.: Diabetes, hypertension, and cardiovascular events in survivors of hematopoietic cell transplantation: a report from the bone marrow transplantation survivor study. Blood 109 (4): 1765-72, 2007.17047152
van Waas M, Neggers SJ, Uitterlinden AG, et al.: Treatment factors rather than genetic variation determine metabolic syndrome in childhood cancer survivors. Eur J Cancer 49 (3): 668-75, 2013.23036851
de Vathaire F, El-Fayech C, Ben Ayed FF, et al.: Radiation dose to the pancreas and risk of diabetes mellitus in childhood cancer survivors: a retrospective cohort study. Lancet Oncol 13 (10): 1002-10, 2012.22921663
Armenian SH, Chemaitilly W, Chen M, et al.: National Institutes of Health Hematopoietic Cell Transplantation Late Effects Initiative: The Cardiovascular Disease and Associated Risk Factors Working Group Report. Biol Blood Marrow Transplant 23 (2): 201-210, 2017.27590105
Lega IC, Pole JD, Austin PC, et al.: Diabetes Risk in Childhood Cancer Survivors: A Population-Based Study. Can J Diabetes 42 (5): 533-539, 2018.29937232
Baker KS, Chow EJ, Goodman PJ, et al.: Impact of treatment exposures on cardiovascular risk and insulin resistance in childhood cancer survivors. Cancer Epidemiol Biomarkers Prev 22 (11): 1954-63, 2013.24008489
Meacham LR, Chow EJ, Ness KK, et al.: Cardiovascular risk factors in adult survivors of pediatric cancer--a report from the childhood cancer survivor study. Cancer Epidemiol Biomarkers Prev 19 (1): 170-81, 2010.20056636
van Santen HM, Geskus RB, Raemaekers S, et al.: Changes in body mass index in long-term childhood cancer survivors. Cancer 121 (23): 4197-204, 2015.26287726
Meacham LR, Gurney JG, Mertens AC, et al.: Body mass index in long-term adult survivors of childhood cancer: a report of the Childhood Cancer Survivor Study. Cancer 103 (8): 1730-9, 2005.15761876
Tonorezos ES, Chou JF, Moskowitz CS, et al.: Risk of increased mortality in underweight survivors: A brief report from the Childhood Cancer Survivor Study. Pediatr Blood Cancer 71 (8): e31080, 2024.38778453
Oeffinger KC, Mertens AC, Sklar CA, et al.: Obesity in adult survivors of childhood acute lymphoblastic leukemia: a report from the Childhood Cancer Survivor Study. J Clin Oncol 21 (7): 1359-65, 2003.12663727 22549704
Sklar CA, Mertens AC, Walter A, et al.: Changes in body mass index and prevalence of overweight in survivors of childhood acute lymphoblastic leukemia: role of cranial irradiation. Med Pediatr Oncol 35 (2): 91-5, 2000.10918229
Garmey EG, Liu Q, Sklar CA, et al.: Longitudinal changes in obesity and body mass index among adult survivors of childhood acute lymphoblastic leukemia: a report from the Childhood Cancer Survivor Study. J Clin Oncol 26 (28): 4639-45, 2008.18824710
Chow EJ, Pihoker C, Hunt K, et al.: Obesity and hypertension among children after treatment for acute lymphoblastic leukemia. Cancer 110 (10): 2313-20, 2007.17896787
Withycombe JS, Post-White JE, Meza JL, et al.: Weight patterns in children with higher risk ALL: A report from the Children's Oncology Group (COG) for CCG 1961. Pediatr Blood Cancer 53 (7): 1249-54, 2009.19688832
Nathan PC, Jovcevska V, Ness KK, et al.: The prevalence of overweight and obesity in pediatric survivors of cancer. J Pediatr 149 (4): 518-25, 2006.17011325
Oeffinger KC: Are survivors of acute lymphoblastic leukemia (ALL) at increased risk of cardiovascular disease? Pediatr Blood Cancer 50 (2 Suppl): 462-7; discussion 468, 2008.18064658
Brennan BM, Rahim A, Blum WF, et al.: Hyperleptinaemia in young adults following cranial irradiation in childhood: growth hormone deficiency or leptin insensitivity? Clin Endocrinol (Oxf) 50 (2): 163-9, 1999.10396357
Pluimakers VG, van Atteveld JE, de Winter DTC, et al.: Prevalence, risk factors, and optimal way to determine overweight, obesity, and morbid obesity in the first Dutch cohort of 2338 long-term survivors of childhood cancer: a DCCSS-LATER study. Eur J Endocrinol 189 (5): 495-507, 2023.37837608
Green DM, Cox CL, Zhu L, et al.: Risk factors for obesity in adult survivors of childhood cancer: a report from the Childhood Cancer Survivor Study. J Clin Oncol 30 (3): 246-55, 2012.22184380
Veringa SJ, van Dulmen-den Broeder E, Kaspers GJ, et al.: Blood pressure and body composition in long-term survivors of childhood acute lymphoblastic leukemia. Pediatr Blood Cancer 58 (2): 278-82, 2012.21793179
Janiszewski PM, Oeffinger KC, Church TS, et al.: Abdominal obesity, liver fat, and muscle composition in survivors of childhood acute lymphoblastic leukemia. J Clin Endocrinol Metab 92 (10): 3816-21, 2007.17652222
Oeffinger KC, Adams-Huet B, Victor RG, et al.: Insulin resistance and risk factors for cardiovascular disease in young adult survivors of childhood acute lymphoblastic leukemia. J Clin Oncol 27 (22): 3698-704, 2009.19564534
Jahnukainen K, Heikkinen R, Henriksson M, et al.: Increased Body Adiposity and Serum Leptin Concentrations in Very Long-Term Adult Male Survivors of Childhood Acute Lymphoblastic Leukemia. Horm Res Paediatr 84 (2): 108-15, 2015.26088403
Dalton VK, Rue M, Silverman LB, et al.: Height and weight in children treated for acute lymphoblastic leukemia: relationship to CNS treatment. J Clin Oncol 21 (15): 2953-60, 2003.12885815
Kohler JA, Moon RJ, Wright S, et al.: Increased adiposity and altered adipocyte function in female survivors of childhood acute lymphoblastic leukaemia treated without cranial radiation. Horm Res Paediatr 75 (6): 433-40, 2011.21464554
Zhang FF, Rodday AM, Kelly MJ, et al.: Predictors of being overweight or obese in survivors of pediatric acute lymphoblastic leukemia (ALL). Pediatr Blood Cancer 61 (7): 1263-9, 2014.24482072
Warner JT, Evans WD, Webb DK, et al.: Body composition of long-term survivors of acute lymphoblastic leukaemia. Med Pediatr Oncol 38 (3): 165-72, 2002.11836715 21826741
Miller TL, Lipsitz SR, Lopez-Mitnik G, et al.: Characteristics and determinants of adiposity in pediatric cancer survivors. Cancer Epidemiol Biomarkers Prev 19 (8): 2013-22, 2010.20647396
Jarfelt M, Lannering B, Bosaeus I, et al.: Body composition in young adult survivors of childhood acute lymphoblastic leukaemia. Eur J Endocrinol 153 (1): 81-9, 2005.15994749
Richard MA, Brown AL, Belmont JW, et al.: Genetic variation in the body mass index of adult survivors of childhood acute lymphoblastic leukemia: A report from the Childhood Cancer Survivor Study and the St. Jude Lifetime Cohort. Cancer 127 (2): 310-318, 2021.33048379
Ness KK, DeLany JP, Kaste SC, et al.: Energy balance and fitness in adult survivors of childhood acute lymphoblastic leukemia. Blood 125 (22): 3411-9, 2015.25814529
Belle FN, Kasteler R, Schindera C, et al.: No evidence of overweight in long-term survivors of childhood cancer after glucocorticoid treatment. Cancer 124 (17): 3576-3585, 2018.30119140
Lindemulder SJ, Stork LC, Bostrom B, et al.: Survivors of standard risk acute lymphoblastic leukemia do not have increased risk for overweight and obesity compared to non-cancer peers: a report from the Children's Oncology Group. Pediatr Blood Cancer 62 (6): 1035-41, 2015.25663378
Gurney JG, Ness KK, Stovall M, et al.: Final height and body mass index among adult survivors of childhood brain cancer: childhood cancer survivor study. J Clin Endocrinol Metab 88 (10): 4731-9, 2003.14557448
Sahakitrungruang T, Klomchan T, Supornsilchai V, et al.: Obesity, metabolic syndrome, and insulin dynamics in children after craniopharyngioma surgery. Eur J Pediatr 170 (6): 763-9, 2011.21107605
Müller HL: Childhood craniopharyngioma: current controversies on management in diagnostics, treatment and follow-up. Expert Rev Neurother 10 (4): 515-24, 2010.20367205
Simoneau-Roy J, O'Gorman C, Pencharz P, et al.: Insulin sensitivity and secretion in children and adolescents with hypothalamic obesity following treatment for craniopharyngioma. Clin Endocrinol (Oxf) 72 (3): 364-70, 2010.19486023
Tosta-Hernandez PDC, Siviero-Miachon AA, da Silva NS, et al.: Childhood Craniopharyngioma: A 22-Year Challenging Follow-Up in a Single Center. Horm Metab Res 50 (9): 675-682, 2018.29959763
van Schaik J, van Roessel IMAA, Schouten-van Meeteren NAYN, et al.: High Prevalence of Weight Gain in Childhood Brain Tumor Survivors and Its Association With Hypothalamic-Pituitary Dysfunction. J Clin Oncol 39 (11): 1264-1273, 2021.33621126
Neville KA, Cohn RJ, Steinbeck KS, et al.: Hyperinsulinemia, impaired glucose tolerance, and diabetes mellitus in survivors of childhood cancer: prevalence and risk factors. J Clin Endocrinol Metab 91 (11): 4401-7, 2006.16954158
Nysom K, Holm K, Michaelsen KF, et al.: Degree of fatness after allogeneic BMT for childhood leukaemia or lymphoma. Bone Marrow Transplant 27 (8): 817-20, 2001.11477438
Ketterl TG, Chow EJ, Leisenring WM, et al.: Adipokines, Inflammation, and Adiposity in Hematopoietic Cell Transplantation Survivors. Biol Blood Marrow Transplant 24 (3): 622-626, 2018.29197678
Inaba H, Yang J, Kaste SC, et al.: Longitudinal changes in body mass and composition in survivors of childhood hematologic malignancies after allogeneic hematopoietic stem-cell transplantation. J Clin Oncol 30 (32): 3991-7, 2012.23032628
Wilson CL, Liu W, Chemaitilly W, et al.: Body Composition, Metabolic Health, and Functional Impairment among Adults Treated for Abdominal and Pelvic Tumors during Childhood. Cancer Epidemiol Biomarkers Prev 29 (9): 1750-1758, 2020.32796078
Ness KK, Krull KR, Jones KE, et al.: Physiologic frailty as a sign of accelerated aging among adult survivors of childhood cancer: a report from the St Jude Lifetime cohort study. J Clin Oncol 31 (36): 4496-503, 2013.24248696
Hayek S, Gibson TM, Leisenring WM, et al.: Prevalence and Predictors of Frailty in Childhood Cancer Survivors and Siblings: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 38 (3): 232-247, 2020.31800343
Delaney A, Howell CR, Krull KR, et al.: Progression of Frailty in Survivors of Childhood Cancer: A St. Jude Lifetime Cohort Report. J Natl Cancer Inst 113 (10): 1415-1421, 2021.33720359
Williams AM, Krull KR, Howell CR, et al.: Physiologic Frailty and Neurocognitive Decline Among Young-Adult Childhood Cancer Survivors: A Prospective Study From the St Jude Lifetime Cohort. J Clin Oncol 39 (31): 3485-3495, 2021.34283634
van Atteveld JE, de Winter DTC, Pluimakers VG, et al.: Frailty and sarcopenia within the earliest national Dutch childhood cancer survivor cohort (DCCSS-LATER): a cross-sectional study. Lancet Healthy Longev 4 (4): e155-e165, 2023.37003274
Guida JL, Hyun G, Belsky DW, et al.: Associations of seven measures of biological age acceleration with frailty and all-cause mortality among adult survivors of childhood cancer in the St. Jude Lifetime Cohort. Nat Cancer 5 (5): 731-741, 2024.38553617

## Late Effects of the Immune System

Late effects of the immune system have not been well studied, especially in survivors treated with contemporary therapies. Reports published about long-term immune system outcomes are limited by retrospective data collection, small sample size, cohort selection and participation bias, heterogeneity in treatment approach, time since treatment, and method of ascertainment.

### Asplenia

Surgical or functional splenectomy increases the risk of life-threatening invasive bacterial infection:[1]

- Although staging laparotomy is no longer standard practice for pediatric Hodgkin lymphoma, patients from earlier treatment periods have ongoing risks.[2]
- Children may be rendered asplenic by radiation therapy to the spleen in doses greater than 30 Gy.[3,4] Low-dose involved-field radiation therapy (21 Gy) combined with multiagent chemotherapy did not appear to adversely affect splenic function, as measured by pitted red blood cell assays.[4] No other studies of immune status after radiation therapy are available.
- Functional asplenia (with Howell-Jolly bodies, reduced splenic size and blood flow) after hematopoietic stem cell transplant (HSCT) has been attributed to graft-versus-host disease (GVHD).[5]
- Childhood Cancer Survivor Study investigators observed a significantly increased risk of late infection-related mortality among survivors who were treated with splenectomy (relative risk [RR], 7.7; 95% confidence interval [CI], 3.1–19.1).[6]
  - Splenic radiation was also associated with a dose-related risk of late infection-related mortality (0.1–9.9 Gy: RR, 2.0; 95% CI, 0.9–4.5; 10.0–19.9 Gy: RR, 5.5; 95% CI, 1.9–15.4; >20.0 Gy: RR, 6.0; 95% CI, 1.8–20.2).
  - The low cumulative incidence of infection-related late mortality of 1.5% at 35 years after splenectomy and 0.6% after splenic radiation indicates that these are rare events.
- A Dutch multicenter cohort study included survivors of Hodgkin lymphoma (n = 4,919; age, <51 years at treatment; median follow-up, 20.2 years) who were treated between 1965 and 2000.[7]
  - The study found that infectious-disease mortality was more than twofold increased, not only among patients who underwent splenectomy, but also in patients who received radiation therapy to the spleen.
  - Infection-related mortality was slightly more increased after spleen irradiation than after splenectomy. This observation was thought to be related to the lower vaccination rate among patients who received spleen irradiation compared with patients who had a splenectomy.

Individuals with asplenia, regardless of the reason for the asplenic state, have an increased risk of fulminant bacteremia, especially associated with encapsulated bacteria, which is associated with a high mortality rate.[8]

The risk of bacteremia is higher in younger children than in older children, and this risk may be higher during the years immediately after splenectomy. Fulminant septicemia, however, has been reported in adults up to 25 years after splenectomy.

Bacteremia may be caused by the following organisms in asplenic survivors:

- Streptococcus pneumoniae. The most common pathogen that causes bacteremia in children with asplenia.
- Other streptococci.
- Haemophilus influenzae type b (Hib).
- Neisseria meningitidis.
- Escherichia coli; Staphylococcus aureus.
- Gram-negative bacilli, such as the Salmonella species, the Klebsiella species, and Pseudomonas aeruginosa.

Individuals with functional or surgical asplenia are also at increased risk of fatal malaria and severe babesiosis.[9]

#### Posttherapy management

- Clinicians should consider and encourage the administration of inactivated vaccines (e.g., influenza) and vaccines made of purified antigens (e.g., pneumococcus), bacterial components (e.g., diphtheria-tetanus-pertussis), or genetically engineered recombinant antigens (e.g., hepatitis B) in all cancer and transplant survivors according to recommended doses and schedules.[10-12]
- Two primary doses of quadrivalent meningococcal conjugate vaccine should be administered 2 months apart to children with asplenia, from age 2 years through adolescence, and a booster dose should be administered every 5 years. For more information, see Meningococcal Vaccination: Recommendations of the Advisory Committee on Immunization Practices, United States, 2020 (https://www.cdc.gov/mmwr/volumes/69/rr/rr6909a1.htm).[13]
  - The efficacy of meningococcal vaccines in children with asplenia has not been established.
  - No known contraindication exists to giving these vaccines at the same time as other required vaccines, in separate syringes, and at different sites.
- Pneumococcal conjugate vaccine (PCV) and pneumococcal polysaccharide vaccine (PPSV) are indicated at the recommended age for all children with asplenia.[14,15]
  - Following the administration of the appropriate number of doses of PCV13, PPSV23 should be administered starting at age 24 months.
  - A second dose should be administered 5 years later.
  - For children aged 2 to 5 years with a complete PCV7 series who have not received PCV13, a supplemental dose of PCV13 should be administered.
  - For asplenic individuals aged 6 to 18 years who have not received a dose of PCV13, a supplemental dose of PCV13 should be considered.
- Hib immunization should be initiated at age 2 months, as recommended for otherwise healthy young children and for previously unimmunized children with asplenia.[15] For more information, see Immunization Schedules (https://www.cdc.gov/vaccines/hcp/imz-schedules/child-adolescent-medical-indication.html?CDC_AAref_Val=https://www.cdc.gov/vaccines/schedules/hcp/imz/child-indications.html).[15]

Daily antimicrobial prophylaxis against pneumococcal infections is recommended for young children with asplenia, regardless of their immunization status.

- Although the efficacy of daily antimicrobial prophylaxis has been proven only in patients with sickle cell anemia, this experience has been extended to other high-risk children, including asplenic children with a history of malignant neoplasms or thalassemia.
- In general, antimicrobial prophylaxis (in addition to immunization) should be considered for all children with asplenia younger than 5 years and for at least 1 year after splenectomy.
- The age at which antimicrobial prophylaxis is discontinued is an empiric decision.
  - On the basis of a multicenter study in sickle cell disease, prophylactic penicillin can be discontinued at age 5 years among those who are receiving regular medical attention and who have not had a severe pneumococcal infection or surgical splenectomy.
  - The appropriate duration of prophylaxis is unknown for children with asplenia attributable to other causes.
  - Some experts continue prophylaxis throughout childhood and into adulthood for particularly high-risk patients with asplenia.

Table 14 summarizes spleen late effects and the related health screenings.

Table 14. Spleen Late Effects^a^

Predisposing Therapy | Immunologic Effects | Health Screening/Interventions
Radiation exposing spleen; splenectomy; HSCT with currently active GVHD | Asplenia/hyposplenia; overwhelming post-splenectomy sepsis | Blood cultures during febrile episodes (T >38.5°C); empiric antibiotics
Radiation exposing spleen; splenectomy; HSCT with currently active GVHD | Asplenia/hyposplenia; overwhelming post-splenectomy sepsis | Immunization for encapsulated organisms (pneumococcal, Haemophilus influenzae type b, and meningococcal vaccines)
HSCT with any history of chronic GVHD | Immunologic complications (secretory IgA deficiency, hypogammaglobulinemia, decreased B cells, T cell dysfunction, chronic infections [e.g., conjunctivitis, sinusitis, and bronchitis associated with chronic GVHD]) | History: chronic conjunctivitis, chronic sinusitis, chronic bronchitis, recurrent or unusual infections, sepsis
HSCT with any history of chronic GVHD | | Examination: attention to eyes, nose/sinuses, and lungs

GVHD = graft-versus-host disease; HSCT = hematopoietic stem cell transplant; IgA = immunoglobulin A; T = temperature.

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

For more information about posttransplant immunization, see the Centers for Disease Control and Prevention (CDC) Guidelines for Preventing Opportunistic Infections Among Hematopoietic Stem Cell Transplant Recipients (https://www.cdc.gov/mmwr/preview/mmwrhtml/rr4910a1.htm).

### Humoral Immunity

Although the immune system appears to recover from the effects of active chemotherapy and radiation therapy, its effect on immune function into survivorship has not been well studied. Most studies have evaluated children treated for acute lymphoblastic leukemia (ALL), which in the disease itself, involves impaired lymphocyte maturation of either T or B cells in addition to lymphotoxic therapy.[16] Small studies suggest that protective titers against vaccine-preventable illnesses can be affected for months to years after non-HSCT childhood cancer therapy. There are no universal standards for the timing of serological evaluations or whether boosters and revaccinations should be given to every survivor.[16]

- Defects in immune recovery characterized by B-cell depletion have been observed in 2-year survivors of standard-risk and intermediate-risk ALL.[17]
- In a retrospective study of 55 childhood cancer survivors who received standard chemotherapy, more than 75% of long-term survivors who received at least one measles, mumps, and rubella (MMR) vaccination before their cancer diagnosis lacked seroprotection to the measles and mumps viruses. This suggests that the interrupted schedule is not sufficient for long-term seroprotection. All childhood cancer survivors who received both doses of the MMR vaccine after completion of their cancer treatment had positive titers against the measles and mumps viruses.[18]
- Survivors of childhood cancer may remain susceptible to vaccine-preventable infections. Treatment intensity, age at diagnosis, and time from treatment are associated with the risk of losing preexisting immunity.[19,20]

While there is a paucity of data regarding the benefits of administering active immunizations in this population, reimmunization is necessary to provide protective antibodies. The recommended reimmunization schedule will depend on previously received vaccinations and on the intensity of therapy.[16]

- In some children who received intensive treatment, consideration may be given to evaluating the antibodies against common vaccination antigens to determine the need for revaccination. For more information, see Immunization Schedules (https://www.cdc.gov/vaccines/hcp/imz-schedules/child-adolescent-medical-indication.html?CDC_AAref_Val=https://www.cdc.gov/vaccines/schedules/hcp/imz/child-indications.html).[15]

Immune status is also compromised after HSCT, particularly in association with GVHD.[21]

- In a prospective longitudinal study of 210 survivors treated with allogeneic HSCT, antibody responses lasting for more than 5 years after immunization were observed in most patients for tetanus (95.7%), rubella (92.3%), poliovirus (97.9%), and, in diphtheria-tetanus-acellular pertussis (DTaP) recipients, diphtheria (100%).[22]
  - Responses to pertussis (25.0%), measles (66.7%), mumps (61.5%), hepatitis B (72.9%), and diphtheria in tetanus-diphtheria (Td) recipients (48.6%) were less favorable.
  - Factors associated with vaccine failure include older age at immunization; lower CD3, CD4, or CD19 count; higher immunoglobulin (Ig) M concentration; positive recipient cytomegalovirus serology; negative titer before immunization; history of acute or chronic GVHD; and radiation conditioning.

The major North American and European transplant groups, the CDC, and the Infectious Diseases Society of America have published follow-up recommendations for transplant recipients.[23-25] The American Society for Transplantation and Cellular Therapy has provided recommendations for preventing measles in patients who received HSCT or chimeric antigen receptor (CAR) T-cell therapy.[26]

Late effects after CD19-targeted CAR T-cell therapy for patients with relapsed or refractory ALL are largely unknown. Many patients will undergo an HSCT after CAR-T cell therapy, which complicates assessment of late effects. The most frequent late effect (as defined as >90 days post CAR T-cell therapy) is hypogammaglobulinemia.

- In a series of 75 children who received CAR T-cell therapy, all patients who responded to treatment (n = 61) experienced B-cell aplasia. There was an 83% probability of ongoing B-cell aplasia at 6 months after treatment with tisagenlecleucel. Ninety percent of responders to CAR T-cell therapy required intravenous (IV) IgG.[27]
- One series included 86 adults (young adults aged 22 years and older were included) who were treated with CAR T cells for CD19-positive refractory or relapsed conditions (ALL, chronic lymphocytic leukemia, and non-Hodgkin lymphoma) and alive for at least 1 year after treatment. Late effects were observed starting or persisting beyond 90 days after CAR T-cell therapy. Hypogammaglobulinemia (IgG <400mg/dL or IV gamma globulin replacement) was observed in 67% of patients with available data.[28]

Preexisting humoral immunity to vaccine-related antigens can persist in patients despite marked B-cell aplasia after CD19-targeted T-cell immunotherapy. Studies have shown that a population of plasma cells lacking CD19 expression survives long-term after CD19 CAR T-cell immunotherapy.[29]

### Infection Risks

Infectious complications resulting in hospitalization occur in excess rates among long-term childhood cancer survivors.[30]

- In a retrospective, population-based, observational study, the incidence rate was 12.6 per 1,000 person-years for infection associated with hospitalization among 5-year childhood cancer survivors, compared with 2.4 for individuals without cancer who were matched for birth year and sex. This represented an incidence rate ratio of 5.1.
- Incident rates remained elevated more than twofold during the 5- to 10-year and longer than 10-year postdiagnosis periods.
- Survivors had a greater risk of infection (incident rate ratio, 13.1) relative to comparators when potentially vaccine-preventable infections were evaluated.

For immune system late effects information, including risk factors, evaluation, and health counseling, see the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### References

Centers for Disease Control and Prevention: Altered immunocompetence. In: Kroger A, Bahta L, Long S, et al.: General Best Practice Guidelines for Immunization: Best Practices Guidance. Atlanta, GA: Advisory Committee on Immunization Practices (ACIP); Centers for Disease Control and Prevention, 2023, pp 123-48. Available online (https://www.cdc.gov/vaccines/hcp/acip-recs/general-recs/immunocompetence.html). Last accessed November 3, 2023.
Jockovich M, Mendenhall NP, Sombeck MD, et al.: Long-term complications of laparotomy in Hodgkin's disease. Ann Surg 219 (6): 615-21; discussion 621-4, 1994.8203970 94263291
Coleman CN, McDougall IR, Dailey MO, et al.: Functional hyposplenia after splenic irradiation for Hodgkin's disease. Ann Intern Med 96 (1): 44-7, 1982.7053701 82089588
Weiner MA, Landmann RG, DeParedes L, et al.: Vesiculated erythrocytes as a determination of splenic reticuloendothelial function in pediatric patients with Hodgkin's disease. J Pediatr Hematol Oncol 17 (4): 338-41, 1995.7583390 96042206
Al-Eid MA, Tutschka PJ, Wagner HN, et al.: Functional asplenia in patients with chronic graft-versus-host disease: concise communication. J Nucl Med 24 (12): 1123-6, 1983.6358431
Weil BR, Madenci AL, Liu Q, et al.: Late Infection-Related Mortality in Asplenic Survivors of Childhood Cancer: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 36 (16): 1571-1578, 2018.29664715
de Vries S, Schaapveld M, Janus CPM, et al.: Long-Term Cause-Specific Mortality in Hodgkin Lymphoma Patients. J Natl Cancer Inst 113 (6): 760-769, 2021.33351090
Madenci AL, Armstrong LB, Kwon NK, et al.: Incidence and risk factors for sepsis after childhood splenectomy. J Pediatr Surg 54 (7): 1445-1448, 2019.30029846
Ram S, Lewis LA, Rice PA: Infections of people with complement deficiencies and patients who have undergone splenectomy. Clin Microbiol Rev 23 (4): 740-80, 2010.20930072
National Center for Immunization and Respiratory Diseases: General recommendations on immunization: recommendations of the Advisory Committee on Immunization Practices (ACIP). MMWR Morb Mortal Wkly Rep 60 (RR02): 1-60, 2011. Available online (https://www.cdc.gov/mmwr/preview/mmwrhtml/rr6002a1.htm). Last accessed August 21, 2023.
Bridges CB, Coyne-Beasley T; Advisory Committee on Immunization Practices: Advisory committee on immunization practices recommended immunization schedule for adults aged 19 years or older: United States, 2014. Ann Intern Med 160 (3): 190, 2014.24658695
Rubin LG, Levin MJ, Ljungman P, et al.: 2013 IDSA clinical practice guideline for vaccination of the immunocompromised host. Clin Infect Dis 58 (3): 309-18, 2014.24421306
Mbaeyi SA, Bozio CH, Duffy J, et al.: Meningococcal Vaccination: Recommendations of the Advisory Committee on Immunization Practices, United States, 2020. MMWR Morb Mortal Wkly Rep 69 (No. RR-9): 1–41, 2020. Available online (http://dx.doi.org/10.15585/mmwr.rr6909a1). Last accessed November 3, 2023.
Centers for Disease Control and Prevention (CDC): Use of 13-valent pneumococcal conjugate vaccine and 23-valent pneumococcal polysaccharide vaccine among children aged 6-18 years with immunocompromising conditions: recommendations of the Advisory Committee on Immunization Practices (ACIP). MMWR Morb Mortal Wkly Rep 62 (25): 521-4, 2013.23803961
Centers for Disease Control and Prevention: Child and Adolescent Immunization Schedule by Medical Indication: Recommendations for Ages 18 Years or Younger, United States, 2025. Atlanta, GA: Centers for Disease Control and Prevention, 2025. Available online (https://www.cdc.gov/vaccines/hcp/imz-schedules/child-adolescent-medical-indication.html?CDC_AAref_Val=https://www.cdc.gov/vaccines/schedules/hcp/imz/child-indications.html). Last accessed January 6, 2025.
Guilcher GMT, Rivard L, Huang JT, et al.: Immune function in childhood cancer survivors: a Children's Oncology Group review. Lancet Child Adolesc Health 5 (4): 284-294, 2021.33600774
Koskenvuo M, Ekman I, Saha E, et al.: Immunological Reconstitution in Children After Completing Conventional Chemotherapy of Acute Lymphoblastic Leukemia is Marked by Impaired B-cell Compartment. Pediatr Blood Cancer 63 (9): 1653-6, 2016.27163649
Speckhart SA: MMR vaccination timing and long-term immunity among childhood cancer survivors. Pediatr Blood Cancer 70 (4): e30133, 2023.36602013
Fayea NY, Fouda AE, Kandil SM: Immunization status in childhood cancer survivors: A hidden risk which could be prevented. Pediatr Neonatol 58 (6): 541-545, 2017.27543381
Bochennek K, Allwinn R, Langer R, et al.: Differential loss of humoral immunity against measles, mumps, rubella and varicella-zoster virus in children treated for cancer. Vaccine 32 (27): 3357-61, 2014.24793952
Olkinuora HA, Taskinen MH, Saarinen-Pihkala UM, et al.: Multiple viral infections post-hematopoietic stem cell transplantation are linked to the appearance of chronic GVHD among pediatric recipients of allogeneic grafts. Pediatr Transplant 14 (2): 242-8, 2010.19691523
Inaba H, Hartford CM, Pei D, et al.: Longitudinal analysis of antibody response to immunization in paediatric survivors after allogeneic haematopoietic stem cell transplantation. Br J Haematol 156 (1): 109-17, 2012.22017512
Tomblyn M, Chiller T, Einsele H, et al.: Guidelines for preventing infectious complications among hematopoietic cell transplantation recipients: a global perspective. Biol Blood Marrow Transplant 15 (10): 1143-238, 2009.19747629
Cordonnier C, Einarsdottir S, Cesaro S, et al.: Vaccination of haemopoietic stem cell transplant recipients: guidelines of the 2017 European Conference on Infections in Leukaemia (ECIL 7). Lancet Infect Dis 19 (6): e200-e212, 2019.30744963
Majhail NS, Rizzo JD, Lee SJ, et al.: Recommended screening and preventive practices for long-term survivors after hematopoietic cell transplantation. Rev Bras Hematol Hemoter 34 (2): 109-33, 2012.23049402
Pergam SA, Englund JA, Kamboj M, et al.: Preventing Measles in Immunosuppressed Cancer and Hematopoietic Cell Transplantation Patients: A Position Statement by the American Society for Transplantation and Cellular Therapy. Biol Blood Marrow Transplant 25 (11): e321-e330, 2019.31394271
Maude SL, Laetsch TW, Buechner J, et al.: Tisagenlecleucel in Children and Young Adults with B-Cell Lymphoblastic Leukemia. N Engl J Med 378 (5): 439-448, 2018.29385370
Cordeiro A, Bezerra ED, Hirayama AV, et al.: Late Events after Treatment with CD19-Targeted Chimeric Antigen Receptor Modified T Cells. Biol Blood Marrow Transplant 26 (1): 26-33, 2020.31419568
Bhoj VG, Arhontoulis D, Wertheim G, et al.: Persistence of long-lived plasma cells and humoral immunity in individuals responding to CD19-directed CAR T-cell therapy. Blood 128 (3): 360-70, 2016.27166358
Chehab L, Doody DR, Esbenshade AJ, et al.: A Population-Based Study of the Long-Term Risk of Infections Associated With Hospitalization in Childhood Cancer Survivors. J Clin Oncol 41 (2): 364-372, 2023.35878085

## Late Effects of the Musculoskeletal System

The musculoskeletal system of growing children and adolescents is vulnerable to the cytotoxic effects of cancer therapies, including surgery, chemotherapy, and radiation therapy. Documented late effects include the following:

- Bone and joint (abnormal bone and/or muscle growth) problems.
- Deformity and functional loss associated with amputation/limb-sparing surgery, joint contracture, osteoporosis/fractures, and osteonecrosis.
- Changes in body composition (obesity and loss of lean muscle mass).

While these late effects are discussed individually, it is important to remember that the components of the musculoskeletal system are interrelated. For example, hypoplasia of a muscle group can negatively affect the function of the long bones and the resultant dysfunction can subsequently lead to disuse and osteoporosis.

The major strength of the published literature documenting musculoskeletal late effects among children and adolescents treated for cancer is that most studies have clearly defined outcomes and exposures. However, many studies are observational and cross-sectional or retrospective in design. Single-institution studies are common, and for some outcomes, only small convenience cohorts have been described. Thus, it is possible that studies either excluded patients with the most severe musculoskeletal effects because of death or inability to participate in follow-up testing, or they oversampled those with the most severe musculoskeletal late effects because these patients were accessible as they returned for complication-related follow-up. Additionally, some of the results reported in adult survivors of childhood cancer may not be relevant to patients currently being treated because the anticancer treatment and delivery of anticancer modalities, particularly radiation therapy, have changed over the years in response to documented toxicities.

### Abnormal Bone Growth

The effect of radiation on bone growth depends on the sites irradiated, as follows:

- Head and brain.
- Spine and long bones.

#### Radiation to the head and brain

In an age- and dose-dependent fashion, radiation can inhibit normal bone and muscle maturation and development.

- Radiation to the head (e.g., cranial, orbital, infratemporal, or nasopharyngeal radiation therapy) can cause craniofacial abnormalities, particularly in children treated before age 5 years who received radiation doses of 20 Gy or higher [1-4] or who were treated with concomitant chemotherapy.[5]
- Soft tissue sarcomas such as orbital rhabdomyosarcoma and retinoblastoma are two of the more common cancer types treated with these radiation fields. Often, in addition to the cosmetic impact of the craniofacial abnormalities, there can be related dental and sinus problems.

Cranial radiation therapy damages the hypothalamic-pituitary axis in an age- and dose-response fashion and can result in growth hormone deficiency.[6,7] If the growth hormone deficiency is not treated during the growing years and, sometimes, even with appropriate treatment, it leads to a substantially lower final height. Patients with a central nervous system (CNS) tumor [8,9] or acute lymphoblastic leukemia (ALL) [10,11] treated with 18 Gy or higher of cranial radiation therapy are at highest risk. Patients treated with single-fraction total-body irradiation (TBI),[12-14] and those treated with cranial radiation for non-CNS solid tumors [15] are also at risk of growth hormone deficiency. If the spine is also irradiated (e.g., craniospinal radiation therapy for medulloblastoma or early ALL therapies in the 1960s), growth can be affected by two separate mechanisms—growth hormone deficiency and direct damage to the spine.

#### Radiation to the spine and long bones

Radiation therapy can also directly affect the growth of the spine and long bones (and associated muscle groups) and can cause premature closure of the epiphyses, leading to the following:[16-18]

- Short stature.
- Asymmetric growth (scoliosis/kyphosis).
- Limb-length discrepancy.

Orthovoltage radiation therapy, commonly used before 1970, delivered high doses of radiation to bone and was commonly associated with subsequent abnormalities in bone growth.

However, even with contemporary radiation therapy, if a solid tumor is located near an epiphysis or the spine, alterations in normal bone development can be difficult to avoid.

The effects of radiation therapy administered to the spine on survivors of CNS tumors and Wilms tumor have been assessed.

Evidence (effect of radiation therapy on the spine and long bones):

1. The effect of craniospinal irradiation (CSI) on bone growth was assessed in 220 pediatric patients with brain tumors who were treated with CSI.[19]
  - Vertebral growth was significantly correlated with radiation dose (>39 Gy) and growth hormone deficiency.
  - Eighty-three percent of patients had fatty marrow changes, 31% had disc degenerative changes (signal change, bulging, and height loss), 13% had degenerative changes of spinal bones, 17% had wedging or spinal height loss, and 27% had scoliosis.
  - Even with symmetrical irradiation to the vertebral bodies, the risk of scoliosis was high after CSI.
  - Age at irradiation was a significant risk factor for scoliosis (P = .0067), but there was no correlation with radiation dose.
  - Adequate growth hormone replacement was important for bone growth.
2. In the National Wilms Tumor Study (studies 1 through 4), stature loss in 2,778 children was evaluated.[20]
  - For those younger than 12 months at diagnosis who received more than 10 Gy of radiation therapy, the estimated adult-height deficit was 7.7 cm when compared with the nonradiation therapy group.
  - For those who received 10 Gy, the estimated trunk shortening was 2.8 cm or less.
  - Among those whose height measurements in the teenage years were available, patients who received more than 15 Gy of radiation therapy were 4 to 7 cm shorter on average than their nonirradiated counterparts, with an evident dose-response relationship.
  - Chemotherapy did not confer additional risk.
3. The effect of radiation therapy on the development of scoliosis has also been re-evaluated. In a group of 42 children treated for Wilms tumor from 1968 to 1994, scoliosis was seen in 18 patients, with only one patient needing orthopedic intervention. The study also suggested that the incidence was lower in patients who received 10 to 12 Gy, which are the dosages currently used for Wilms tumor. However, the sample size was small.[21]
4. In a cohort of 245 long-term survivors of ALL (median follow-up, 15.1 years), the prevalence of and risk factors for vertebral deformities were assessed by spine radiographs and dual-energy x-ray absorptiometry scans.[22]
  - Vertebral deformities were prevalent in 23% of patients, with 88% of them categorized as Genant grade 1 (>20%–25% reduction in percentage of anterior, middle, or posterior vertebral height ratios).
  - Independent predictors of prevalent vertebral deformity included male sex (relative risk [RR], 1.94; 95% CI, 1.16–3.24), higher cumulative glucocorticoid dose (RR, 1.05; 95% CI, 1.00–1.10), and back pain (RR, 2.44; 95% CI, 1.56–3.84).
  - Lumbar spine bone mineral density Z-score and age at and time from diagnosis were not significant predictors of vertebral deformity. However, sex-stratified analyses indicated that lumbar spine Z-score was significantly predictive of vertebral deformity in males.

### Osteoporosis and Fractures

Although increased rates of fracture are not reported among long-term survivors of childhood cancer,[23] maximal peak bone mass is an important factor influencing the risk of osteoporosis and fracture among older patients. Treatment-related factors that affect bone mineral loss include the following:

- Chemotherapy. Methotrexate has a cytotoxic effect on osteoblasts, resulting in a reduction of bone volume and formation of new bone.[24] This effect may be exacerbated by the chronic use of corticosteroids, another class of agents routinely used in the treatment of hematological malignancies and in supportive care for a variety of pediatric cancers.
- Radiation therapy. Radiation-related endocrinopathies, such as growth hormone deficiency or hypogonadism, may contribute to ongoing bone mineral loss.[25,26]
- Nutrition and activity. Suboptimal nutrition and physical inactivity may further predispose to deficits in bone mineral accretion.

Most of our knowledge about cancer and treatment effects on bone mineralization has been derived from studies of children with ALL.

- In children with ALL, the leukemic process, and possibly vitamin D deficiency, may play a role in the alterations in bone metabolism and bone mass observed at diagnosis.[27]
- Antileukemic therapy causes additional bone mineral density loss,[28] which has been reported to normalize over time [29] or to persist for many years after completion of therapy.[30]
- Clinical factors predicting higher risk of low bone mineral density include treatment with the following:[31-33]
  - High cumulative doses of methotrexate (>40 g/m^2^).
  - High cumulative doses of corticosteroids (>9 g/m^2^).
  - Cranial radiation therapy or craniospinal radiation therapy.
  - More potent glucocorticoids such as dexamethasone.
  - The development of osteonecrosis during treatment for ALL.[34]

Clinical assessment of bone mineral density in adults treated for childhood ALL indicates that most bone mineral deficits normalize over time after discontinuing osteotoxic therapy.[32]

Evidence (low bone mineral density):

1. Dutch Childhood Oncology Group (DCOG)–LATER investigators evaluated the risk factors for low and very low bone mineral density, any fractures, and vertebral fractures with dual-energy x-ray absorptiometry in 3,996 5-year survivors of childhood cancer (mean age, 33 years at participation). Self-reported fractures were assessed among all participants, and vertebral fractures were assessed among a subset of participants.[26]
  - The standardized incidence ratio of any first fracture was 3.53 (95% confidence interval [CI], 3.06–4.06) for male participants and 5.35 (4.46–6.52) for female participants. Thirty-three of 249 (13.3%) participants had vertebral fractures.
  - Risk factors for low bone mineral density at any site included male sex, being underweight, exposure to high-dose carboplatin, exposure to any dose of cranial radiation therapy, hypogonadism, hyperthyroidism, low physical activity, and severe vitamin D deficiency.
  - Risk factors for very low bone marrow density at any site included male sex, being underweight, exposure to cranial radiation therapy, growth hormone deficiency, and severe vitamin D deficiency.
  - Risk factors for any fracture included male sex, former and current smoking status, and very low lumbar spine bone mineral density.
  - Risk factors for vertebral fractures included older age at follow-up, previous treatment with platinum compounds, growth hormone deficiency, and low physical activity.
2. Bone mineral density deficits were assessed in 3,919 5-year survivors (median age, 31.7 years) in the St. Jude Life (SJLIFE) cohort. Treatment exposures, comorbid conditions, and smoking status/sedentary behavior explained 18.5%, 10.2%, and 7.0% of moderate bone mineral density deficit cases, respectively. These items also explained 55.4%, 51.1%, and 9.9% of severe bone mineral deficit cases, respectively.[35]
  - Severe bone mineral deficits were associated with 30 Gy or higher cranial radiation therapy (OR, 5.22), testicular or pelvic radiation therapy (OR, 1.70), hypogonadism (OR, 3.27), growth hormone deficiency (OR, 5.28), smoking (OR, 1.70), and sedentary behavior (OR, 2.06).
  - Survivors with bone mineral deficits were less likely to live alone or be employed. They were also more likely to require assistance with personal care, to report depressive symptoms, and to report poor quality of life.
3. Bone mineral density deficits have been reported in long-term survivors of childhood brain tumors.[36]
  - Among 50 survivors of medulloblastoma or CNS supratentorial primitive neuroectodermal tumors (median follow-up, 19.5 years), decreased bone marrow density z-scores were detected in 48% of the lumbar spine and 34% of the total body measurements.
  - Modifiable risk factors for bone marrow density deficits included low serum calcium (62%) and vitamin D (26%), low vitamin D intake (69%), and inactive lifestyle (62%).
  - Male sex, older age at diagnosis, and lower lean body mass index (BMI) were associated with increased risk of decreased bone marrow density z-scores.
4. Among 862 ALL survivors (median age, 31.3 years) evaluated by quantitative computed tomography of L1 through L2 vertebrae, the following was reported:[25]
  - 30% of survivors had low bone mineral density (z-score below -1), and 18.6% of survivors met criteria for frailty or prefrailty.
  - The prefrail phenotype is characterized by having two of five characteristics (low muscle mass, self-reported exhaustion, low energy expenditure, slow walking speed, and weakness), and the frail phenotype is characterized by having three or more of these characteristics.
  - Modifiable factors such as growth hormone deficiency, smoking, and alcohol consumption were significant predictors for these outcomes, with varying impact on the basis of sex.
  - These data underscore the importance of lifestyle counseling and screening for hormonal deficits during long-term survivors' follow-up evaluations.
5. A cohort of 845 adult survivors of childhood ALL were evaluated at a median age of 31 years.[32]
  - Very low bone mineral density was relatively uncommon, with only 5.7% of patients with bone mineral density z-scores consistent with osteoporosis and 23.8% of patients with bone mineral density z-scores consistent with osteopenia.
  - Cranial radiation dose of 24 Gy or higher, but not cumulative methotrexate or prednisone equivalent doses, was associated with a twofold elevated risk of bone mineral density z-scores of -1 or lower.
  - In a subset of 400 survivors with longitudinal bone mineral density evaluations, bone mineral density z-scores tended to improve from adolescence to young adulthood.
6. Bone mineral density deficits that are likely multifactorial in etiology have been reported in allogeneic hematopoietic stem cell transplant (HSCT) recipients conditioned with TBI.
  - French investigators observed a significant risk of lower femoral bone mineral density among adult survivors of childhood leukemia treated with HSCT who had gonadal deficiency.[37]
  - Hormonal therapy has been shown to enhance the bone mineral density of adolescent girls diagnosed with hypogonadism after HSCT.[38]
7. A cross-sectional study evaluated the prevalence of and risk factors for vitamin D deficiency (<20 ng/mL) and its association with bone mineral density in 446 long-term childhood cancer survivors (median age, 27.5 years; median time from completion of therapy, 14.2 years).[39]
  - Vitamin D deficiency was present in 24% of survivors.
  - Independent predictors of vitamin D deficiency included high BMI (odds ratio [OR], 1.78 for patients who are overweight; OR, 2.4 for patients with obesity) and Hispanic or Black race and ethnicity (OR, 2.4).
  - Survivors with vitamin D deficiency had a more-than-threefold risk (OR, 3.58) of reduced bone mineral density.

#### Fracture risk in childhood cancer survivors

- Despite disease-related and treatment-related risks of bone mineral density deficits, the prevalence of self-reported fractures among Childhood Cancer Survivor Study (CCSS) participants was lower than that reported by sibling controls. Predictors of increased prevalence of fracture by multivariable analyses included the following:[23]
  - Among female survivors, increasing age at follow-up, White race, methotrexate treatment, and balance difficulties.
  - Among male survivors, smoking history and White race.
- Radiation-induced fractures can occur with doses of radiation of 50 Gy or higher, which are often used to treat Ewing sarcoma of the extremity.[40]

#### Risk prediction model for bone mineral density deficits

Data from the SJLIFE cohort study (development) and Erasmus Medical Center (validation) in the Netherlands were used to develop and validate prediction models for low and very low bone mineral density on the basis of clinical and treatment characteristics that identify adult survivors of childhood cancer who require screening by dual-energy x-ray absorptiometry.[41]

- Low bone mineral density was defined as lumbar spine bone mineral density and/or total-body bone mineral density z-score of -1 or lower; very low bone mineral density was defined as a z-score of -2 or lower.
- Low bone mineral density was present in 51% of SJLIFE study participants and 45% of Dutch participants, represented by survivors of both hematologic and solid malignancies. Very low bone mineral density was present in 20% of SJLIFE study participants and 10% of Dutch participants.
- The model, which included male sex, height, weight, attained age, current smoking status, and cranial irradiation, showed good performance for predicting risk of low bone mineral density (areas under the curve of 0.72 in the SJLIFE cohort and 0.69 in the Dutch cohort).
- The model, which included male sex, height, weight, attained age, cranial irradiation, and abdominal irradiation, showed good performance for predicting risk of very low bone mineral density (areas under the curve of 0.76 in the SJLIFE cohort and 0.75 in the Dutch cohort).
- These models correctly identified bone mineral density status in most White adult survivors through age 40 years using easily measured patient and treatment characteristics.
- The calculator to determine the predicted probability of low and very low bone mineral density for an individual survivor is available online (https://riskcalculator-bonemineraldensity-childhoodcancer.azurewebsites.net/).

### Osteonecrosis

Osteonecrosis (also known as aseptic or avascular necrosis) is a rare, but well-recognized skeletal complication observed predominantly in survivors of pediatric hematological malignancies treated with corticosteroids.[42] The condition is characterized by death of one or more segments of bone that most often affects weight-bearing joints, especially the hips and knees.

- The prevalence of osteonecrosis has varied from 1% to 22% based on the study population, treatment protocol, method of evaluation, and time from treatment.[42-48]
- Longitudinal cohort studies have identified a spectrum of clinical manifestations of osteonecrosis, ranging from asymptomatic, spontaneously resolving imaging changes to painful progressive articular collapse requiring joint replacement.[49]
- Symptomatic osteonecrosis characterized by pain, joint swelling, and reduced mobility typically presents during the first 2 years of therapy, particularly in patients with ALL.
- These symptoms may improve over time, persist, or progress in the years after completion of therapy.[50] In one series, 60% of patients continued to have symptoms at a median follow-up of 4.9 years after diagnosis of osteonecrosis.[51]
- Impaired physical performance and reduced quality of life have been observed in long-term survivors of childhood leukemia and lymphoma (mean age, 28 years) with osteonecrosis.[52]
- Surgical procedures, including core decompression, osteotomy, and joint replacements, are sometimes performed in patients with persistently severe symptoms.[51] Percutaneous autologous mesenchymal stem cells have also been used for the treatment of ankle osteonecrosis in childhood and adolescent leukemia survivors.[53]

Factors that increase the risk of osteonecrosis include the following:

#### Exposure to corticosteroids and, possibly, methotrexate and concurrent asparaginase

- The most important treatment factor associated with the development of osteonecrosis is prolonged exposure to corticosteroids, which is typical in treatment regimens used for ALL, Hodgkin lymphoma, non-Hodgkin lymphoma, and HSCT.[47-49,54-56]
- Osteonecrosis risk may be related to type of corticosteroid, with some studies in patients with ALL indicating increased risk with the use of dexamethasone compared with prednisone.[57,58]
- Corticosteroid dosing schedule also appears to impact the risk of developing osteonecrosis. In the Children’s Oncology Group (COG)-1961 trial for newly diagnosed high-risk ALL, patients were randomly assigned to receive either continuous (daily) dexamethasone or an alternate-week schedule of dexamethasone during the delayed intensification phase. The alternate-week schedule was associated with a lower incidence of osteonecrosis.[42]
- In addition to corticosteroids, exposure to methotrexate and concurrent asparaginase may contribute to the development of osteonecrosis.

#### Development of thromboembolism during antileukemic therapy

- In a retrospective review of 208 children treated for ALL, investigators at McMaster University reported a 5.21-fold (95% CI, 1.82–14.91) increased odds of osteonecrosis among children who experienced thromboembolism during antileukemic therapy than among those who did not have a thromboembolism, even after accounting for age and asparaginase exposure.[59]

#### HSCT conditioning and course

- In a large case-control study that evaluated risk factors for osteonecrosis using data from the Center for International Blood and Marrow Transplant Research, lower risks of osteonecrosis were seen in patients with nonmalignant diseases and in those who had received reduced-intensity conditioning regimens for malignant diseases than were seen in patients receiving myeloablative regimens for malignant diseases.[60]
- Several studies have reported an increased risk of osteonecrosis in association with chronic graft-versus-host disease (GVHD).[45,54,60]

#### Age at time of diagnosis or transplant

- Several studies have demonstrated that age at diagnosis (or at time of transplant) is a significant independent predictor of osteonecrosis.[42,47,57]
- Osteonecrosis is significantly more common in older children and adolescents than in younger children. In the COG-1961 trial for high-risk ALL, the 5-year cumulative incidence of symptomatic osteonecrosis was 1.0% for patients aged 1 to 9 years, 9.9% for patients aged 10 to 15 years, and 20% for patients aged 16 to 21 years (P < .0001).[42]

#### Race

- Osteonecrosis occurs more frequently in White patients than in Black patients.[55,61]

#### Genetic factors

- Genetic factors influencing folate metabolism, glucocorticoid metabolism, and adipogenesis have been linked to excess risk of osteonecrosis among survivors.[55,62,63]
- Two candidate gene studies indicate that children homozygous for a 28–base pair repeat within the 5’ untranslated region of the TYMS gene are at increased risk of osteonecrosis.[55,63] This gene is associated with folate production and replacement and is inhibited by methotrexate.
- St. Jude Children's Research Hospital investigators observed an almost sixfold (OR, 5.6; 95% CI, 2.7–11.3) risk of osteonecrosis among survivors with polymorphism of the ACP1 gene, which regulates lipid levels and osteoblast differentiation.[46]
- Genome-wide association studies have identified potential risk variants in the BMP7, PROX1::AS1 fusion, GRID2 (children younger than 10 years), and GRIN3A genes, which are all associated with glucocorticoid receptor activity.[62,64]

#### Sex

- Studies evaluating the influence of sex on the risk of osteonecrosis have yielded conflicting results, with some suggesting a higher incidence in females [51,61,65] that has not been confirmed by others.[66]

#### Adolescent and young adults (AYA)

Chronic comorbidities were assessed in a cohort of 6,778 2-year survivors of AYA cancer (defined as diagnosed with cancer between the ages of 15 and 39 years), with a median follow-up of 5.1 years after cancer diagnosis. The risk of developing chronic comorbidities was compared with matched individuals without a history of cancer. The incidence rate ratio (IRR) for all comorbidities was highest for osteonecrosis (IRR, 8.3), followed by osteoporosis (IRR, 5.75), and joint replacement (IRR, 3.89). The use of methotrexate (IRR, 21.6 for any dose) and corticosteroids (IRR, 5.4 for any dose) was significantly associated with osteonecrosis.[67]

### Osteochondroma

- Osteochondromas are benign bony protrusions that can be spontaneous or associated with radiation therapy. They generally occur as a single lesion. However, multiple lesions may develop in the context of hereditary multiple osteochondromatosis.[68]
- Growth hormone therapy may influence the onset and pace of growth of osteochondromas.[14,69]
- Because malignant degeneration of these lesions is exceptionally rare, clinical rather than radiological follow-up is most appropriate.[70]
- Surgical resection is only necessary when the lesion interferes with joint alignment and movement.[71]

Evidence (risk of osteochondroma):

1. Approximately 5% of children undergoing myeloablative HSCT will develop osteochondroma, which most commonly presents in the metaphyseal regions of long bones.[68,72]
2. A large Italian study reported a 6.1% cumulative risk of developing osteochondroma at 15 years posttransplant, with increased risk associated with younger age at transplant (≤3 years) and use of TBI.[73]
3. Osteochondromas have been reported in patients with neuroblastoma who received local radiation therapy, anti-GD2 monoclonal antibody therapy, and isotretinoin.[74]
  - Osteochondromas occurred at a median of 8.2 years from diagnosis, and the cumulative incidence rate was 4.9% at 10 years from diagnosis among 362 patients younger than 10 years.
  - In this series, most of the osteochondromas were unrelated to radiation and had features characteristic of benign developmental osteochondroma.
  - The pathogenic role for chemotherapy, anti-GD2 monoclonal antibody therapy, or isotretinoin in the development of osteochondroma remains speculative.

### Amputation and Limb-Sparing Surgery

Amputation and limb-sparing surgery prevent local recurrence of bone tumors by removal of all gross and microscopic disease. If optimally executed, both procedures accomplish an en bloc excision of tumor with a margin of normal uninvolved tissue.

- The type of surgical procedure, the primary tumor site, and the age of the patient affect the risk of postsurgical complications.[75]
- Complications in survivors treated with amputation include prosthetic fit problems, chronic pain in the residual limb, phantom limb pain, and bone overgrowth.[75,76]
- While limb-sparing surgeries may offer a more aesthetically pleasing outcome, complications have been reported more frequently in survivors who underwent these procedures than in those treated with amputation.[75,77]
- Complications after limb-sparing surgery include nonunion, pathological fracture, aseptic loosening, limb-length discrepancy, endoprosthetic fracture, and limited joint range of motion.[75,77]
- Occasionally, refractory complications develop after limb-sparing surgery and require amputation.[78,79]

A number of studies have compared functional outcomes after amputation and limb-sparing surgery, but results have been limited by inconsistent methods of functional assessment and small cohort sizes.

- Overall, data suggest that limb-sparing surgery results in better function than amputation, but differences are relatively modest.[75,79,80]
- Similarly, long-term quality-of-life outcomes among survivors undergoing amputation and limb-sparing procedures have not differed substantially.[78]
- A longitudinal analysis of health status among extremity sarcoma survivors in the CCSS indicates an association between lower extremity amputation and increasing activity limitations with age, and an association between upper extremity amputation and lower educational attainment.[81]

CCSS investigators evaluated risk factors for and outcomes of late amputation in survivors treated for lower extremity sarcomas.[82]

- The cumulative incidence of amputation at 25 years after cancer diagnosis and primary limb-sparing surgery was 18% and did not differ significantly among survivors diagnosed in the 1970s (27%) versus the 1980s (19%) and 1990s (15%).
- Factors associated with an increased risk of late amputation included male sex (hazard ratio [HR], 2.2; 95% CI, 1.07–3.82) and history of prosthetic joint reconstruction (HR, 2.58; 95% CI, 1.37–4.84).
- Survivors treated with primary amputation and those experiencing late amputation after limb-sparing surgery were more likely to report impaired physical functioning (RR, 1.31; 95% CI, 1.04–1.72 and RR, 2.46; 95% CI, 1.66–3.63, respectively) and worse bodily pain scores (RR, 1.50; 95% CI, 1.10–2.06 and RR, 2.33; 95% CI, 1.27–4.26, respectively) than those without amputation after limb-sparing surgery.

The incidence of late major surgical interventions among childhood cancer survivors was examined through data from the CCSS. In the report, survivors of Ewing sarcoma and osteosarcoma had the highest cumulative burden of late, major surgical interventions among all solid tumor survivors (mean cumulative counts of late surgical interventions was 322.9 per 100 survivors of Ewing sarcoma and 269.6 per 100 survivors of osteosarcoma). A large component of this burden is related to the increased rate of additional late musculoskeletal surgeries, such as arthroplasty, amputation, prosthetic revision caused by an infection, device failure, or associated fractures. Locoregional surgery or radiation therapy cancer treatments were associated with undergoing late surgical intervention in the same body region or organ system.[83]

### Joint Contractures

HSCT with any history of chronic GVHD is associated with joint contractures.[84,85]

Table 15 summarizes bone and joint late effects and the related health screenings.

Table 15. Bone and Joint Late Effects^a^

Predisposing Therapy | Musculoskeletal Effects | Health Screening
Radiation exposing musculoskeletal system | Hypoplasia; fibrosis; reduced/uneven growth (scoliosis, kyphosis); limb length discrepancy | Examination: bones and soft tissues in radiation fields
Radiation exposing head and neck | Craniofacial abnormalities | History: psychosocial assessment, with attention to educational and/or vocational progress, depression, anxiety, posttraumatic stress, social withdrawal
Radiation exposing head and neck | Craniofacial abnormalities | Head and neck examination
Radiation exposing musculoskeletal system | Radiation-induced fracture | Examination of affected bone
Methotrexate; corticosteroids (dexamethasone, prednisone); radiation exposing skeletal structures; HSCT | Reduced bone mineral density | Bone mineral density test (DXA or quantitative CT)
Corticosteroids (dexamethasone, prednisone) | Osteonecrosis | History: joint pain, swelling, immobility, limited range of motion
Corticosteroids (dexamethasone, prednisone) | Osteonecrosis | Musculoskeletal examination
Radiation with exposure to oral cavity | Osteoradionecrosis | History/oral examination: impaired or delayed healing after dental work, persistent jaw pain or swelling, trismus
Amputation | Amputation-related complications (impaired cosmesis, functional/activity limitations, residual limb integrity, chronic pain, increased energy expenditure) | History: pain, functional/activity limitations
Amputation | Amputation-related complications (impaired cosmesis, functional/activity limitations, residual limb integrity, chronic pain, increased energy expenditure) | Examination: residual limb integrity
Amputation | Amputation-related complications (impaired cosmesis, functional/activity limitations, residual limb integrity, chronic pain, increased energy expenditure) | Prosthetic evaluation
Limb-sparing surgery | Limb-sparing surgical complications (functional/activity limitations, fibrosis, contractures, chronic infection, chronic pain, limb length discrepancy, increased energy expenditure, prosthetic malfunction [loosening, nonunion, fracture]) | History: pain, functional/activity limitations
Limb-sparing surgery | | Examination: residual limb integrity
Limb-sparing surgery | | Radiograph of affected limb
Limb-sparing surgery | | Orthopedic evaluation
HSCT with any history of chronic GVHD | Joint contracture | Musculoskeletal examination

CT = computed tomography; DXA = dual-energy x-ray absorptiometry; GVHD = graft-versus-host disease; HSCT = hematopoietic stem cell transplant.

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

For musculoskeletal system late effects information, including risk factors, evaluation, and health counseling, see the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### References

Estilo CL, Huryn JM, Kraus DH, et al.: Effects of therapy on dentofacial development in long-term survivors of head and neck rhabdomyosarcoma: the memorial sloan-kettering cancer center experience. J Pediatr Hematol Oncol 25 (3): 215-22, 2003.12621240
Gevorgyan A, La Scala GC, Neligan PC, et al.: Radiation-induced craniofacial bone growth disturbances. J Craniofac Surg 18 (5): 1001-7, 2007.17912072
Karsila-Tenovuo S, Jahnukainen K, Peltomäki T, et al.: Disturbances in craniofacial morphology in children treated for solid tumors. Oral Oncol 37 (7): 586-92, 2001.11564580
Choi SY, Kim MS, Yoo S, et al.: Long term follow-up results of external beam radiotherapy as primary treatment for retinoblastoma. J Korean Med Sci 25 (4): 546-51, 2010.20357996
Shildkrot Y, Kirzhner M, Haik BG, et al.: The effect of cancer therapies on pediatric anophthalmic sockets. Ophthalmology 118 (12): 2480-6, 2011.21856015
Brownstein CM, Mertens AC, Mitby PA, et al.: Factors that affect final height and change in height standard deviation scores in survivors of childhood cancer treated with growth hormone: a report from the childhood cancer survivor study. J Clin Endocrinol Metab 89 (9): 4422-7, 2004.15356041
Nandagopal R, Laverdière C, Mulrooney D, et al.: Endocrine late effects of childhood cancer therapy: a report from the Children's Oncology Group. Horm Res 69 (2): 65-74, 2008.18059086
Sklar CA, Constine LS: Chronic neuroendocrinological sequelae of radiation therapy. Int J Radiat Oncol Biol Phys 31 (5): 1113-21, 1995.7713777
Packer RJ, Boyett JM, Janss AJ, et al.: Growth hormone replacement therapy in children with medulloblastoma: use and effect on tumor control. J Clin Oncol 19 (2): 480-7, 2001.11208842 21126183
Chow EJ, Friedman DL, Yasui Y, et al.: Decreased adult height in survivors of childhood acute lymphoblastic leukemia: a report from the Childhood Cancer Survivor Study. J Pediatr 150 (4): 370-5, 375.e1, 2007.17382112
Bongers ME, Francken AB, Rouwé C, et al.: Reduction of adult height in childhood acute lymphoblastic leukemia survivors after prophylactic cranial irradiation. Pediatr Blood Cancer 45 (2): 139-43, 2005.15714445
Leung W, Ahn H, Rose SR, et al.: A prospective cohort study of late sequelae of pediatric allogeneic hematopoietic stem cell transplantation. Medicine (Baltimore) 86 (4): 215-24, 2007.17632263
Sanders JE: Growth and development after hematopoietic cell transplant in children. Bone Marrow Transplant 41 (2): 223-7, 2008.17922039
Sanders JE, Guthrie KA, Hoffmeister PA, et al.: Final adult height of patients who received hematopoietic cell transplantation in childhood. Blood 105 (3): 1348-54, 2005.15454481
Shalitin S, Laur E, Lebenthal Y, et al.: Endocrine complications and components of the metabolic syndrome in survivors of childhood malignant non-brain solid tumors. Horm Res Paediatr 81 (1): 32-42, 2014.24246763
Silber JH, Littman PS, Meadows AT: Stature loss following skeletal irradiation for childhood cancer. J Clin Oncol 8 (2): 304-12, 1990.2299373 90132838
Hartley KA, Li C, Laningham FH, et al.: Vertebral body growth after craniospinal irradiation. Int J Radiat Oncol Biol Phys 70 (5): 1343-9, 2008.18164830
Paulino AC, Nguyen TX, Mai WY: An analysis of primary site control and late effects according to local control modality in non-metastatic Ewing sarcoma. Pediatr Blood Cancer 48 (4): 423-9, 2007.16421909
Oshiro Y, Mizumoto M, Pan H, et al.: Spinal changes after craniospinal irradiation in pediatric patients. Pediatr Blood Cancer 67 (12): e28728, 2020.33009883
Hogeboom CJ, Grosser SC, Guthrie KA, et al.: Stature loss following treatment for Wilms tumor. Med Pediatr Oncol 36 (2): 295-304, 2001.11452938 21345515
Paulino AC, Wen BC, Brown CK, et al.: Late effects in children treated with radiation therapy for Wilms' tumor. Int J Radiat Oncol Biol Phys 46 (5): 1239-46, 2000.10725637 20191774
Fiscaletti M, Samoilenko M, Dubois J, et al.: Predictors of Vertebral Deformity in Long-Term Survivors of Childhood Acute Lymphoblastic Leukemia: The PETALE Study. J Clin Endocrinol Metab 106 (2): 512-525, 2021.33150433
Wilson CL, Dilley K, Ness KK, et al.: Fractures among long-term survivors of childhood cancer: a report from the Childhood Cancer Survivor Study. Cancer 118 (23): 5920-8, 2012.22605509
Davies JH, Evans BA, Jenney ME, et al.: Skeletal morbidity in childhood acute lymphoblastic leukaemia. Clin Endocrinol (Oxf) 63 (1): 1-9, 2005.15963054
Wilson CL, Chemaitilly W, Jones KE, et al.: Modifiable Factors Associated With Aging Phenotypes Among Adult Survivors of Childhood Acute Lymphoblastic Leukemia. J Clin Oncol 34 (21): 2509-15, 2016.27001572
van Atteveld JE, de Winter DTC, Pluimakers VG, et al.: Risk and determinants of low and very low bone mineral density and fractures in a national cohort of Dutch adult childhood cancer survivors (DCCSS-LATER): a cross-sectional study. Lancet Diabetes Endocrinol 11 (1): 21-32, 2023.36513116
van der Sluis IM, van den Heuvel-Eibrink MM, Hählen K, et al.: Altered bone mineral density and body composition, and increased fracture risk in childhood acute lymphoblastic leukemia. J Pediatr 141 (2): 204-10, 2002.12183715 22171001
Arikoski P, Komulainen J, Riikonen P, et al.: Reduced bone density at completion of chemotherapy for a malignancy. Arch Dis Child 80 (2): 143-8, 1999.10325729
Brennan BM, Mughal Z, Roberts SA, et al.: Bone mineral density in childhood survivors of acute lymphoblastic leukemia treated without cranial irradiation. J Clin Endocrinol Metab 90 (2): 689-94, 2005.15562013
Warner JT, Evans WD, Webb DK, et al.: Relative osteopenia after treatment for acute lymphoblastic leukemia. Pediatr Res 45 (4 Pt 1): 544-51, 1999.10203147
Mandel K, Atkinson S, Barr RD, et al.: Skeletal morbidity in childhood acute lymphoblastic leukemia. J Clin Oncol 22 (7): 1215-21, 2004.15051768
Gurney JG, Kaste SC, Liu W, et al.: Bone mineral density among long-term survivors of childhood acute lymphoblastic leukemia: results from the St. Jude Lifetime Cohort Study. Pediatr Blood Cancer 61 (7): 1270-6, 2014.24585546
den Hoed MA, Klap BC, te Winkel ML, et al.: Bone mineral density after childhood cancer in 346 long-term adult survivors of childhood cancer. Osteoporos Int 26 (2): 521-9, 2015.25209410
den Hoed MA, Pluijm SM, te Winkel ML, et al.: Aggravated bone density decline following symptomatic osteonecrosis in children with acute lymphoblastic leukemia. Haematologica 100 (12): 1564-70, 2015.26405155
Goodenough CG, Baedke JL, Delaney AM, et al.: Attributable Risk and Consequences of Bone Mineral Density Deficits in Childhood Cancer Survivors. JAMA Netw Open 8 (1): e2454069, 2025.39792384
Kvammen JA, Stensvold E, Godang K, et al.: Bone mineral density and nutrition in long-term survivors of childhood brain tumors. Clin Nutr ESPEN 50: 162-169, 2022.35871919
Le Meignen M, Auquier P, Barlogis V, et al.: Bone mineral density in adult survivors of childhood acute leukemia: impact of hematopoietic stem cell transplantation and other treatment modalities. Blood 118 (6): 1481-9, 2011.21596857
Kodama M, Komura H, Shimizu S, et al.: Efficacy of hormone therapy for osteoporosis in adolescent girls after hematopoietic stem cell transplantation: a longitudinal study. Fertil Steril 95 (2): 731-5, 2011.21067714
Bhandari R, Teh JB, Herrera C, et al.: Prevalence and risk factors for vitamin D deficiency in long-term childhood cancer survivors. Pediatr Blood Cancer 68 (7): e29048, 2021.33822476
Paulino AC: Late effects of radiotherapy for pediatric extremity sarcomas. Int J Radiat Oncol Biol Phys 60 (1): 265-74, 2004.15337565
van Atteveld JE, Pluijm SMF, Ness KK, et al.: Prediction of Low and Very Low Bone Mineral Density Among Adult Survivors of Childhood Cancer. J Clin Oncol 37 (25): 2217-2225, 2019.31169453
Mattano LA, Devidas M, Nachman JB, et al.: Effect of alternate-week versus continuous dexamethasone scheduling on the risk of osteonecrosis in paediatric patients with acute lymphoblastic leukaemia: results from the CCG-1961 randomised cohort trial. Lancet Oncol 13 (9): 906-15, 2012.22901620
Bürger B, Beier R, Zimmermann M, et al.: Osteonecrosis: a treatment related toxicity in childhood acute lymphoblastic leukemia (ALL)--experiences from trial ALL-BFM 95. Pediatr Blood Cancer 44 (3): 220-5, 2005.15514916
Karimova EJ, Rai SN, Howard SC, et al.: Femoral head osteonecrosis in pediatric and young adult patients with leukemia or lymphoma. J Clin Oncol 25 (12): 1525-31, 2007.17442995
Campbell S, Sun CL, Kurian S, et al.: Predictors of avascular necrosis of bone in long-term survivors of hematopoietic cell transplantation. Cancer 115 (18): 4127-35, 2009.19536905
Kawedia JD, Kaste SC, Pei D, et al.: Pharmacokinetic, pharmacodynamic, and pharmacogenetic determinants of osteonecrosis in children with acute lymphoblastic leukemia. Blood 117 (8): 2340-7; quiz 2556, 2011.21148812
Girard P, Auquier P, Barlogis V, et al.: Symptomatic osteonecrosis in childhood leukemia survivors: prevalence, risk factors and impact on quality of life in adulthood. Haematologica 98 (7): 1089-97, 2013.23645686
Ali N, Gohar S, Zaky I, et al.: Osteonecrosis in children with acute lymphoblastic leukemia: A report from Children's Cancer Hospital Egypt (CCHE). Pediatr Blood Cancer 66 (1): e27440, 2019.30183135
Karimova EJ, Wozniak A, Wu J, et al.: How does osteonecrosis about the knee progress in young patients with leukemia?: a 2- to 7-year study. Clin Orthop Relat Res 468 (9): 2454-9, 2010.20582497
Padhye B, Dalla-Pozza L, Little D, et al.: Incidence and outcome of osteonecrosis in children and adolescents after intensive therapy for acute lymphoblastic leukemia (ALL). Cancer Med 5 (5): 960-7, 2016.26792372
te Winkel ML, Pieters R, Hop WC, et al.: Prospective study on incidence, risk factors, and long-term outcome of osteonecrosis in pediatric acute lymphoblastic leukemia. J Clin Oncol 29 (31): 4143-50, 2011.21947829
DeFeo BM, Kaste SC, Li Z, et al.: Long-Term Functional Outcomes Among Childhood Survivors of Cancer Who Have a History of Osteonecrosis. Phys Ther 100 (3): 509-522, 2020.32044966
Hernigou P, Auregan JC, Dubory A, et al.: Ankle osteonecrosis in fifty-one children and adolescent's leukemia survivors: a prospective randomized study on percutaneous mesenchymal stem cells treatment. Int Orthop 45 (9): 2383-2393, 2021.33893522
Faraci M, Calevo MG, Lanino E, et al.: Osteonecrosis after allogeneic stem cell transplantation in childhood. A case-control study in Italy. Haematologica 91 (8): 1096-9, 2006.16885050
Relling MV, Yang W, Das S, et al.: Pharmacogenetic risk factors for osteonecrosis of the hip among children with leukemia. J Clin Oncol 22 (19): 3930-6, 2004.15459215
Giertz M, Aarnivala H, Wilk Michelsen S, et al.: Symptomatic osteonecrosis in children treated for Hodgkin lymphoma: A population-based study in Sweden, Finland, and Denmark. Pediatr Blood Cancer 71 (11): e31250, 2024.39140964
Vrooman LM, Stevenson KE, Supko JG, et al.: Postinduction dexamethasone and individualized dosing of Escherichia Coli L-asparaginase each improve outcome of children and adolescents with newly diagnosed acute lymphoblastic leukemia: results from a randomized study--Dana-Farber Cancer Institute ALL Consortium Protocol 00-01. J Clin Oncol 31 (9): 1202-10, 2013.23358966
Hyakuna N, Shimomura Y, Watanabe A, et al.: Assessment of corticosteroid-induced osteonecrosis in children undergoing chemotherapy for acute lymphoblastic leukemia: a report from the Japanese Childhood Cancer and Leukemia Study Group. J Pediatr Hematol Oncol 36 (1): 22-9, 2014.24136019
Badhiwala JH, Nayiager T, Athale UH: The development of thromboembolism may increase the risk of osteonecrosis in children with acute lymphoblastic leukemia. Pediatr Blood Cancer 62 (10): 1851-4, 2015.25931304
Li X, Brazauskas R, Wang Z, et al.: Avascular necrosis of bone after allogeneic hematopoietic cell transplantation in children and adolescents. Biol Blood Marrow Transplant 20 (4): 587-92, 2014.24388803
Mattano LA, Sather HN, Trigg ME, et al.: Osteonecrosis as a complication of treating acute lymphoblastic leukemia in children: a report from the Children's Cancer Group. J Clin Oncol 18 (18): 3262-72, 2000.10986059 20442263
Karol SE, Mattano LA, Yang W, et al.: Genetic risk factors for the development of osteonecrosis in children under age 10 treated for acute lymphoblastic leukemia. Blood 127 (5): 558-64, 2016.26590194
Finkelstein Y, Blonquist TM, Vijayanathan V, et al.: A thymidylate synthase polymorphism is associated with increased risk for bone toxicity among children treated for acute lymphoblastic leukemia. Pediatr Blood Cancer 64 (7): , 2017.27957785
Karol SE, Yang W, Van Driest SL, et al.: Genetics of glucocorticoid-associated osteonecrosis in children with acute lymphoblastic leukemia. Blood 126 (15): 1770-6, 2015.26265699
Aricò M, Boccalatte MF, Silvestri D, et al.: Osteonecrosis: An emerging complication of intensive chemotherapy for childhood acute lymphoblastic leukemia. Haematologica 88 (7): 747-53, 2003.12857552
Elmantaser M, Stewart G, Young D, et al.: Skeletal morbidity in children receiving chemotherapy for acute lymphoblastic leukaemia. Arch Dis Child 95 (10): 805-9, 2010.20576660
Chao C, Bhatia S, Xu L, et al.: Chronic Comorbidities Among Survivors of Adolescent and Young Adult Cancer. J Clin Oncol 38 (27): 3161-3174, 2020.32673152
Bovée JV: Multiple osteochondromas. Orphanet J Rare Dis 3: 3, 2008.18271966
Bordigoni P, Turello R, Clement L, et al.: Osteochondroma after pediatric hematopoietic stem cell transplantation: report of eight cases. Bone Marrow Transplant 29 (7): 611-4, 2002.11979312
Taitz J, Cohn RJ, White L, et al.: Osteochondroma after total body irradiation: an age-related complication. Pediatr Blood Cancer 42 (3): 225-9, 2004.14752859
King EA, Hanauer DA, Choi SW, et al.: Osteochondromas after radiation for pediatric malignancies: a role for expanded counseling for skeletal side effects. J Pediatr Orthop 34 (3): 331-5, 2014 Apr-May.23965908
Danner-Koptik K, Kletzel M, Dilley KJ: Exostoses as a long-term sequela after pediatric hematopoietic progenitor cell transplantation: potential causes and increase risk of secondary malignancies from Ann & Robert H. Lurie Children's Hospital of Chicago. Biol Blood Marrow Transplant 19 (8): 1267-70, 2013.23721826
Faraci M, Bagnasco F, Corti P, et al.: Osteochondroma after hematopoietic stem cell transplantation in childhood. An Italian study on behalf of the AIEOP-HSCT group. Biol Blood Marrow Transplant 15 (10): 1271-6, 2009.19747635
Kushner BH, Roberts SS, Friedman DN, et al.: Osteochondroma in long-term survivors of high-risk neuroblastoma. Cancer 121 (12): 2090-6, 2015.25728463
Nagarajan R, Neglia JP, Clohisy DR, et al.: Limb salvage and amputation in survivors of pediatric lower-extremity bone tumors: what are the long-term implications? J Clin Oncol 20 (22): 4493-501, 2002.12431974 22319162
Aulivola B, Hile CN, Hamdan AD, et al.: Major lower extremity amputation: outcome of a modern series. Arch Surg 139 (4): 395-9; discussion 399, 2004.15078707
Kaste SC, Neel MN, Rao BN, et al.: Complications of limb-sparing procedures using endoprosthetic replacements about the knee for pediatric skeletal sarcomas. Pediatr Radiol 31 (2): 62-71, 2001.11214687
Eiser C, Darlington AS, Stride CB, et al.: Quality of life implications as a consequence of surgery: limb salvage, primary and secondary amputation. Sarcoma 5 (4): 189-95, 2001.18521313
Renard AJ, Veth RP, Schreuder HW, et al.: Function and complications after ablative and limb-salvage therapy in lower extremity sarcoma of bone. J Surg Oncol 73 (4): 198-205, 2000.10797332
Fernandez-Pineda I, Hudson MM, Pappo AS, et al.: Long-term functional outcomes and quality of life in adult survivors of childhood extremity sarcomas: a report from the St. Jude Lifetime Cohort Study. J Cancer Surviv 11 (1): 1-12, 2017.27262580
Marina N, Hudson MM, Jones KE, et al.: Changes in health status among aging survivors of pediatric upper and lower extremity sarcoma: a report from the childhood cancer survivor study. Arch Phys Med Rehabil 94 (6): 1062-73, 2013.23380347
Geiger EJ, Liu W, Srivastava DK, et al.: What Are Risk Factors for and Outcomes of Late Amputation After Treatment for Lower Extremity Sarcoma: A Childhood Cancer Survivor Study Report. Clin Orthop Relat Res 481 (3): 526-538, 2023.35583517
Dieffenbach BV, Murphy AJ, Liu Q, et al.: Cumulative burden of late, major surgical intervention in survivors of childhood cancer: a report from the Childhood Cancer Survivor Study (CCSS) cohort. Lancet Oncol 24 (6): 691-700, 2023.37182536
Beredjiklian PK, Drummond DS, Dormans JP, et al.: Orthopaedic manifestations of chronic graft-versus-host disease. J Pediatr Orthop 18 (5): 572-5, 1998 Sep-Oct.9746402
Inamoto Y, Storer BE, Petersdorf EW, et al.: Incidence, risk factors, and outcomes of sclerosis in patients with chronic graft-versus-host disease. Blood 121 (25): 5098-103, 2013.23547053

## Late Effects of the Reproductive System

Reproductive outcomes in childhood cancer survivors may be compromised by surgery, radiation therapy, or chemotherapy that negatively affects any component of the hypothalamic-pituitary axis or gonads. Evidence for this outcome in childhood cancer survivors is limited by studies characterized by small sample size, cohort selection and participation bias, cross-sectional assessment, heterogeneity in treatment approach, time since treatment, and method of ascertainment. In particular, the literature is deficient regarding hard outcomes of reproductive potential (e.g., semen analysis in men, primordial follicle count in women) and outcomes after contemporary risk-adapted treatment approaches.[1,2]

The risk of infertility is generally related to the tissues or organs involved by the cancer and the specific type, dose, and combination of cytotoxic therapy.

- In pediatric patients with germ cell tumors, orchiectomy or oophorectomy may reduce germ cell numbers.
- Alkylating agents and similar DNA interstrand cross-linking agents are used in the treatment of pediatric cancers. They are the primary chemotherapeutic agents associated with a high risk of infertility. Factors influencing the risk of gonadal injury in children treated with alkylating agent chemotherapy include the following:
  - Cumulative dose.
    Earlier studies used the alkylating agent dose to define dose levels associated with the risk of gonadal toxicity within a specific study cohort. Childhood Cancer Survivor Study (CCSS) investigators developed the cyclophosphamide equivalent dose, which is a metric for normalization of the cumulative doses of various alkylating agents that is independent of the study population. The alkylating agent dose and cyclophosphamide equivalent dose perform similarly when used in several models for different survivor outcomes that include treatment exposures, but only the cyclophosphamide equivalent dose permits comparison across variably treated cohorts. Investigations that evaluate risk factors for gonadal toxicity vary in the use of cumulative doses based on individual alkylating agents, the alkylating agent dose, and the cyclophosphamide equivalent dose.[3]
  - The specific alkylating agent.
  - The length of treatment.
  - Age at treatment.
  - Sex.
- The risk of radiation injury to the hypothalamic-pituitary axis or gonads is related to the treatment volume, total dose, fractionation schedule, and age at treatment.

The St. Jude Children's Research Hospital reported the cumulative risk of hypogonadism and infertility in a cohort of 156 pediatric patients with medulloblastomas who were treated with surgery, risk-adapted craniospinal irradiation, and dose-intensive chemotherapy in the SJMB03 study (2003–2013).[4]

- For the entire cohort, the 5-year cumulative incidence of hypogonadism was 33.9%, and the 10-year cumulative incidence was 45.1%.
- The 10-year cumulative incidence of hypogonadism was 82.4% for women and 18% for men (P < .0001).
- The incidence was 62.9% for patients who had achieved puberty at the time of radiation therapy and 40.1% for those who had not achieved puberty (P = .0068).
- The incidence was 80.6% for those who received a high gonadal radiation dose (>2 Gy), 67.7% for those who received an intermediate gonadal radiation dose (1–2 Gy), and 31.9% for those who received a low gonadal radiation dose (<1 Gy) (P < .0001).
- Hypogonadism was associated with sex, puberty status, gonadal radiation dose exposure, interval from treatment to puberty, and vincristine dose.
- The cumulative incidence of infertility at 10 years was 55.4% for women and 23.5% for men (n = 33; P = .0389).

In addition to anticancer therapy, age at treatment, and sex, it is likely that genetic factors influence the risk of permanent infertility. Pediatric cancer treatment protocols often prescribe combined-modality therapy; thus, the additive effects of gonadotoxic exposures may need to be considered in assessing reproductive potential. Detailed information about the specific cancer treatment modalities, including specific surgical procedures, the type and cumulative doses of chemotherapeutic agents, and radiation treatment volumes and doses, are needed to estimate risks for gonadal dysfunction and infertility.

The treatment-indicated risk of infertility does not simply translate into adult fertility status. This is particularly important for patients who were unable to participate in sperm/oocyte preservation because of their young age when diagnosed and treated for cancer.

- In a study of survivors from a St. Jude Life (SJLIFE) cohort (N = 1,067), most adult survivors of childhood cancer (61.9%) considered themselves at risk of infertility, which was significantly associated with sociodemographic factors (older age, White ethnicity, being married/partnered, higher education), gonadotoxic treatment, fertility concerns, previous unsuccessful attempts to conceive, and sexual dysfunction (all P < .05).[5]
  - Risk perceptions were often discordant from laboratory-evaluated gonadal functioning. Laboratory-evaluated impaired gonadal function was found in 24% of female survivors and 56% of male survivors, but concordance with survivors’ risk perceptions was low. Most survivors with discordant perceptions overestimated risk (20% of male and 44% of female survivors).
  - Survivors who are at risk—such as those who show initial signs of fertility problems and/or those who are experiencing fertility-related uncertainties, worries, or distress—should be offered fertility testing.

### Testis

Cancer treatments that may impair testicular and reproductive function include the following:

- Surgery (orchiectomy, retroperitoneal lymph node dissection, extensive pelvic dissection).
- Radiation therapy (exposing the hypothalamic-pituitary axis or testes).
- Chemotherapy (alkylating agents and similar DNA interstrand cross-linking agents such as procarbazine).
- Hematopoietic stem cell transplant (HSCT).

#### Surgery affecting testicular function

- Patients who undergo unilateral orchiectomy for testicular torsion may have subnormal sperm counts at long-term follow-up.[6,7]
- Retrograde ejaculation is a frequent complication of bilateral retroperitoneal lymph node dissection performed on males with testicular neoplasms.[8,9] Long-term outcomes after minimally invasive retroperitoneal lymph node dissection are not available.[10]
- Erectile dysfunction may occur after extensive pelvic dissections to remove a rhabdomyosarcoma of the prostate.[11,12]

#### Radiation affecting testicular function

Among men who were treated for childhood cancer, gonadal injury may have occurred if radiation treatment fields included the pelvis, gonads, or total body.

- The germinal epithelium is more sensitive to radiation injury than the androgen-producing Leydig cells.
- A decrease in sperm counts can be seen 3 to 6 weeks after such irradiation. Depending on the dosage, recovery may take 1 to more than 3 years.[13]
- The germinal epithelium is damaged by much lower dosages (<1 Gy) of radiation than are Leydig cells (20–30 Gy).[13]
- Irreversible germ cell failure may occur with fractionated radiation doses of greater than 2 Gy to 4 Gy.[13]
- Administration of higher radiation doses, such as 24 Gy, which was used for the treatment of testicular relapse of acute lymphoblastic leukemia (ALL), results in both germ cell failure and Leydig cell dysfunction.[14]

Radiation injury to Leydig cells is related to the dose delivered and age at treatment.

- Testosterone production may be normal in prepubertal boys treated with less than 12 Gy fractionated testicular irradiation, but elevated plasma concentrations of luteinizing hormone observed in this group suggest subclinical injury.[15]
- Leydig cell failure typically results when prepubertal boys are treated with more than 20 Gy of radiation to the testes. Androgen therapy is required for masculinization.[15]
- Leydig cell function is usually preserved in sexually mature male patients if radiation doses do not exceed 30 Gy.[15]
- Although available data suggest that Leydig cells are more vulnerable when exposed to radiation before puberty, confounding factors, such as the age at testing and the effects of both orchiectomy and chemotherapy, limit the reliability of this observation.[15]

#### Chemotherapy affecting testicular function

Cumulative alkylating agent (e.g., cyclophosphamide, mechlorethamine, dacarbazine) dose is an important factor in estimating the risk of testicular germ cell injury. However, limited data are available that correlate results of semen analyses in clinically well-characterized cohorts.[16]

- In general, Leydig cell function is preserved, but germ cell failure is common in men treated with high cumulative doses of cyclophosphamide (7,500 mg/m^2^ or more) and more than 3 months of combination alkylating agent therapy.
- Most studies suggest that prepubertal males are not at lower risk of chemotherapy-induced testicular damage than are postpubertal patients.[17-20]

Studies of testicular germ cell injury, as evidenced by oligospermia or azoospermia, after alkylating agent administration with or without radiation therapy have reported the following:

- Cyclophosphamide:
  - Male survivors of non-Hodgkin lymphoma who received a cumulative cyclophosphamide dose of greater than 9.5 g/m^2^ and underwent pelvic radiation therapy were at increased risk of failure to recover spermatogenesis.[21]
  - In survivors of Ewing sarcoma and soft tissue sarcoma, treatment with a cumulative cyclophosphamide dose of greater than 7.5 g/m^2^ was correlated with persistent oligospermia or azoospermia.[22]
  - Cyclophosphamide doses exceeding 7.5 g/m^2^ and ifosfamide doses exceeding 60 g/m^2^ produced oligospermia or azoospermia in most exposed individuals.[23-25]
  - A small cohort study reported normal semen quality in adult long-term survivors of childhood ALL treated with 0 to 10 g/m^2^ of cyclophosphamide and cranial irradiation, whereas no spermatozoa were detected in semen samples from survivors treated with more than 20 g/m^2^ of cyclophosphamide.[26]
  - Treatment with a cyclophosphamide equivalent dose of less than 4 g/m^2^ results in infrequent azoospermia or oligospermia. Approximately 89% of 31 men treated were normospermic.[27]
  - Spermatogenesis was present in 67% of 15 men who received 200 mg/kg of cyclophosphamide before undergoing HSCT for aplastic anemia.[28]
- Dacarbazine:
  - The combination of doxorubicin, bleomycin, vinblastine, and dacarbazine (ABVD) frequently produced oligospermia or azoospermia in adults during the course of treatment. However, recovery of spermatogenesis occurred after treatment was completed, which is in contrast to the experience reported after treatment with mechlorethamine, vincristine, procarbazine, and prednisone (MOPP).[29]
- Alkylating agent plus procarbazine:
  - Most studies suggest that combination chemotherapy with an alkylating agent and procarbazine causes severe damage to the testicular germinal epithelium that is irreversible at high cumulative doses.[17,30-33]
  - Azoospermia occurred less frequently in adults after treatment with two, rather than six, cycles of MOPP.[34]
  - Elevation of the basal follicle-stimulating hormone (FSH) level, which may reflect impaired spermatogenesis, was less frequent among patients who received two courses of vincristine, procarbazine, prednisone, and doxorubicin (OPPA) than among those who received two courses of OPPA in combination with two or more courses of cyclophosphamide, vincristine, procarbazine and prednisone (COPP).[35]
- Alkylating agents plus low-dose cranial radiation:
  - In a cross-sectional study that included male adult survivors of pediatric ALL who had received alkylating agent chemotherapy with or without cranial radiation, St. Jude Children's Research Hospital investigators demonstrated that cranial radiation at doses lower than 26 Gy has no demonstrable independent effect on spermatogenesis.[36]

#### Testicular function after hematopoietic stem cell transplant (HSCT)

The risk of gonadal dysfunction and infertility related to conditioning with total-body irradiation (TBI), high-dose alkylating agent chemotherapy, or both is substantial.[37] Because patients with relapsed or refractory cancer often undergo HSCT, previous treatment with alkylating agent chemotherapy or hypothalamic-pituitary axis or gonadal radiation therapy may confer additional risks.

- A population-based study used the National Quality Registry for Childhood Cancer in Sweden to assess the prevalence and predictors of endocrine and reproductive outcomes in young adult survivors. This nationwide study consisted of 1,212 male childhood cancer survivors aged 19 to 40 years. Of these, 99 had undergone an HSCT with or without TBI.[38]
  - For patients who underwent HSCT (with and without TBI), the observed prevalence of hormone-inducted puberty was 11.0%. The prevalence of testosterone replacement therapy (TRT) was 30.2%, and the prevalence of having biological children was 9.1%.
  - After HSCT, the ORs were 4.5 for induced puberty and 13 for TRT. Receiving both hormone-induced puberty and ongoing TRT were both significantly associated with HSCT (OR, 10.50, P < .001), compared with not receiving hormone induced-puberty or ongoing TRT.
- A retrospective longitudinal analysis of data obtained over a 30-year period from a tertiary care HSCT unit included 130 males who were younger than 18 years when they underwent a transplant and who survived 2 years or longer after HSCT. Fifty-six percent of the patients were prepubertal, while 44% were peri- or postpubertal when undergoing an HSCT.[39]
  - Patients who were prepubertal before undergoing HSCT had a reduced risk of developing hypogonadism after HSCT (OR, 0.15), despite overall smaller testicular volume achieved in adulthood.
  - Chemotherapy-only regimens were associated with statistically larger testicular volume (P < .001), higher testosterone levels (P = .008), and lower gonadotropin levels (P < .001) than TBI.
  - Evidence of progressively declining Leydig cell function over time was seen by a downward trend in testosterone levels after the achievement of full pubertal attainment, despite a compensatory increase in LH levels.
  - TBI and busulfan exposures were associated with the lowest probability of gonadal event–free courses (P < .0001).
- A French L.E.A. long-term follow-up study evaluated testosterone deficiency in male childhood leukemia survivors after treatment with HSCT or testicular irradiation.[37]
  - Among 178 patients treated with myeloablative TBI, 55.6% had total testosterone deficiency, 15.7% had partial deficiency, and 28.7% were normal. A testicular boost of 4 to 6 Gy of radiation therapy and a younger age at HSCT significantly increased the risk.
  - Among 53 patients who received a busulfan-containing myeloablative conditioning regimen, 28.3% had total deficiency, 15.1% had partial deficiency, 56.6% were normal. For patients who received this regimen and additional testicular radiation, 0% were normal, compared with 62.5% of patients who did not receive additional testicular radiation.
  - Treatment with 24 Gy of testicular radiation without HSCT induced total or partial deficiency in 71.4% and 28.6% of patients, respectively (n = 21).
- Age at treatment also influences the risk of gonadal injury. Young boys and adolescents treated with high-dose cyclophosphamide (200 mg/kg) will generally maintain Leydig cell function and testosterone production, but germ cell failure is common.[40]
- After TBI conditioning, most male patients retain their ability to produce testosterone but will experience germ cell failure.[40]
- Limited data suggest that a greater proportion of boys will retain germinal function or recovery of spermatogenesis (based on pubertal progress and gonadotropin levels) after reduced-intensity conditioning with fludarabine/melphalan than will those treated with myeloablative conditioning with busulfan/cyclophosphamide.[41]

#### Recovery of germ cell function

Recovery of germ cell function after cytotoxic chemotherapy and radiation therapy is possible. However, evidence based on hard outcomes like sperm count is limited. Most studies use hormonal biomarkers like inhibin B and FSH levels to estimate the presence of spermatogenesis. However, limitations in the specificity and positive predictive value of these tests have been reported.[42,43] Male survivors should be advised that semen analysis is the most accurate assessment of adequacy of spermatogenesis.

#### Leydig cell function in long-term survivors of childhood cancer

Leydig cell function in childhood cancer survivors has not been well studied.

In a population-based study that used the National Quality Registry for Childhood Cancer in Sweden, 1,212 male childhood cancer survivors aged 19 to 40 years (median age at diagnosis, 7 years; median age at study, 29 years; treated 1981–2017) participated in a self-reported survey about hormonal treatments and the ability to father a biological child.[38]

- In this nationwide cohort, 3.8% of the survivors had undergone hormonal treatment to induce puberty, 6.0% indicated they were receiving ongoing TRT, and 28.2% reported having a biological child.
- Men who had undergone cranial radiation therapy or HSCT and those younger at diagnosis had increased odds of hormone-induced puberty and reported more ongoing TRT. Men who had an HSCT were 11 times more likely to have a continued need for TRT after induction.
- For most survivors who underwent hormone-induced puberty, testosterone was combined with growth hormone. Half of the survivors who underwent hormone-induced puberty had no ongoing TRT at young adult age and showed a good prognosis for partnering and having biological children.
- Men receiving TRT had a higher prevalence of other endocrine deficiencies (7–8 times higher) and taking cholesterol and cardiac medications, compared with men who did not receive TRT. They had a lower probability of living with a partner, experiencing paternity, or having a current occupation. These men also reported increased fatigue and depressive symptoms.

SJLIFE study investigators evaluated the prevalence of and risk factors for Leydig cell failure and Leydig cell dysfunction in 1,516 men (median age, 30.8 years; median time from diagnosis, 22 years).[44]

- The prevalence of Leydig cell failure (defined as testosterone <250 ng/dL and luteinizing hormone >9.85 IU/L) was 6.9%.
- The prevalence of Leydig cell dysfunction (defined as testosterone ≥250 ng/dL and luteinizing hormone >9.85 IU/L) was 14.7%.
- Independent risk factors for Leydig cell failure included attained age of 26 years or older at assessment, testicular radiation therapy at any dose, and alkylating agents at cyclophosphamide equivalent doses of 4,000 mg/m^2^ or higher.
- Unilateral orchiectomy and similar risk factors for Leydig cell failure were associated with Leydig cell dysfunction.
- The risk of Leydig cell failure and dysfunction increased with older age, higher radiation doses, and increased alkylating agent exposure.
- Adverse outcomes significantly associated with Leydig cell failure (but not Leydig cell dysfunction) included abdominal obesity, diabetes mellitus, erectile dysfunction, muscle weakness, and all-cause mortality.

### Ovary

Cancer treatments that may impair ovarian function/reserve include the following:

- Surgery (oophorectomy).
- Radiation therapy (exposing the hypothalamic-pituitary axis or ovaries).
- Chemotherapy (alkylating agents, similar DNA interstrand cross-linking agents like procarbazine).
- HSCT.

#### Surgery affecting ovarian function

The main challenge for the pediatric surgeon in the management of ovarian tumors is finding the right balance between optimal tumor resection and maximal fertility preservation. Oophorectomy performed for the management of germ cell tumors may reduce ovarian reserve. Contemporary treatments use fertility-sparing surgical procedures combined with systemic chemotherapy to reduce this risk.[45]

#### Radiation affecting ovarian function

In women treated for childhood cancer, primary gonadal injury may have occurred if treatment fields involved the lumbosacral spine, abdomen, pelvis, or total body. The frequency of ovarian failure after abdominal radiation therapy is related to both the age of the patient at the time of irradiation and the radiation therapy dose received by the ovaries. The ovaries of younger individuals are more resistant to radiation damage than those of older women because of their greater complement of primordial follicles.

Whole-abdomen irradiation at doses of 20 Gy or higher is associated with the greatest risk of ovarian dysfunction. Seventy-one percent of patients in one series failed to enter puberty, and 26% of women experienced premature menopause after receiving whole-abdominal radiation therapy doses of 20 Gy to 30 Gy.[46] Other studies reported similar results in women treated with whole-abdomen irradiation [47] or craniospinal irradiation [48,49] during childhood.

#### Chemotherapy affecting ovarian function

Ovarian function may be impaired after treatment with combination chemotherapy that includes an alkylating agent and procarbazine. In general, girls maintain gonadal function at higher cumulative alkylating agent doses than do boys. Most female childhood cancer survivors who are treated with risk-adapted combination chemotherapy retain or recover ovarian function. However, the risk of acute ovarian failure and premature menopause is substantial if treatment includes combined-modality therapy with alkylating agent chemotherapy and abdominal or pelvic radiation therapy or dose-intensive alkylating agents for myeloablative conditioning before HSCT.[50-55]

#### Premature ovarian failure

Premature ovarian failure is well documented in childhood cancer survivors, especially in women treated with both an alkylating agent and abdominal radiation therapy.[50,54-57]

Studies have associated the following factors with an increased rate of premature ovarian insufficiency (acute ovarian failure and premature menopause):

- Age at the time of treatment and attained age.
- Increasing doses of abdominal-pelvic radiation therapy.
- Exposure to alkylating agents and/or procarbazine.
- Oophorectomy.

The presence of apparently normal ovarian function at the completion of chemotherapy should not be interpreted as evidence that no ovarian injury has occurred.

Evidence (excess risk of premature ovarian insufficiency after chemotherapy and radiation):

1. A CCSS study of 2,008 survivors of unilateral nonsyndromic Wilms tumor found the following:[58]
  - The 35-year cumulative incidence of premature ovarian insufficiency was 7.3% (95% confidence interval [CI], 5.0–9.7).
  - Survivors of Wilms tumor who were treated with more intense therapy (including radiation therapy) experienced greater rates of premature ovarian insufficiency, compared with survivors who were treated with vincristine and dactinomycin alone.
2. The menopausal status of 2,930 survivors (median age, 35 years) participating in the CCSS was compared with that of 1,399 siblings. Nonsurgical premature menopause was defined as sustained menses cessation occurring for more than 6 months, beginning 5 years after the cancer diagnosis but before age 40 years, that was not caused by pregnancy, surgery, or medications.[54]
  - The prevalence of nonsurgical premature menopause was 9.1% at age 40 years in these survivors.
  - In multivariable analyses, significant independent risk factors for the development of nonsurgical premature menopause were the following:
    - Exposure to a dose of procarbazine greater than 4,000 mg/m^2^ (odds ratio [OR], 8.96; 95% CI, 5.02–16.00; P < .0001).
    - Exposure to any dose of radiation therapy to the ovaries (OR, 2.73 [95% CI, 1.33–5.61; P = .0062] for a dose of less than 5 Gy and OR, 8.02 [95% CI, 2.81–22.85; P < .0001] for a dose of greater than 5 Gy).
    - Receipt of an HSCT (OR, 6.35; 95% CI, 1.19–33.93; P = .0307).
  - A cyclophosphamide equivalent dose of 6,000 mg/m^2^ or higher that included procarbazine was significant in the univariate analysis, but it did not achieve significance in the multivariable analysis.
  - For survivors who received more than 4,000 mg/m^2^ of procarbazine, the prevalence of nonsurgical premature menopause at age 40 years was 39.7%, compared with 4.2% among those who did not receive any procarbazine (P < .0001).
  - Radiation exposure to the ovaries of greater than 5 Gy resulted in a prevalence of nonsurgical premature menopause at age 40 years of 24.1%, compared with a prevalence of 3.0% in those who did not receive radiation (P < .0001).
  - Cyclophosphamide exposure (at any dose), unilateral oophorectomy, smoking status, and body mass index (BMI) were not found to be significant for the risk of nonsurgical premature menopause.
  - Compared with survivors who did not develop nonsurgical premature menopause, those who developed nonsurgical premature menopause were less likely to ever be pregnant or to have a live birth between the ages of 31 and 40 years. There was no difference in the pregnancy and live birth rates before the age of 30 years for survivors who ultimately developed nonsurgical premature menopause and those who do not.
3. A French cohort study of 1,109 female survivors of childhood solid cancer identified the risk factors for nonsurgical menopause, which included treatment with alkylating agents, radiation exposing the ovaries, and oophorectomy.[57]
  - Women treated with alkylating agents after the onset of puberty, either alone (relative risk [RR], 9.0; 95% CI, 2.7–28.0; P = .0003) or associated with a low dose of radiation to the ovaries (RR, 29; 95% CI, 8–108; P < .0001), had the highest risk ratio for nonsurgical menopause.
  - The overall rate of nonsurgical menopause by age 40 years was only 2.1% and substantially lower than the CCSS and European Organization for Research and Treatment of Cancer cohort studies that include survivors of hematological malignancies.
  - Unilateral oophorectomy was associated with a 7-year-earlier age at menopause.
4. European survivors of Hodgkin lymphoma treated between the ages 15 years and 40 years and who were not receiving hormonal contraceptives were surveyed for the occurrence of premature ovarian failure.[56]
  - In 460 women, premature ovarian failure was mainly influenced by alkylating chemotherapy use with a linear dose relationship between alkylating chemotherapy and premature ovarian failure occurrence.
  - Premature ovarian failure risk increased by 23% per year of age at treatment. In women treated without alkylating chemotherapy before age 32 years, cumulative premature ovarian failure risks were 3%, and at age 32 years or older, the same risks were 9%.
  - If menstruation returned after treatment, cumulative premature ovarian failure risk was independent of age at treatment.
  - Among women who ultimately developed premature ovarian failure, 22% had one or more children after treatment, compared with 41% of women without premature ovarian failure who had one or more children after treatment.
  - This report indicates that women with proven fertility after treatment can still face infertility problems at a later stage.
5. SJLIFE study investigators evaluated the prevalence of and risk factors for premature ovarian insufficiency in 921 female childhood cancer survivor participants. Premature ovarian insufficiency was clinically assessed and defined by persistent amenorrhea combined with an FSH level of 30 IU/L or higher before age 40 years.[59]
  - The prevalence of premature ovarian insufficiency was 10.9% among women who were a median age of 31.7 years at study assessment and a median 24 years from cancer diagnosis.
  - Independent risk factors for premature ovarian insufficiency included ovarian radiation therapy at any dose and cyclophosphamide equivalent dose of 8,000 mg/m^2^ or higher.
  - Obesity (BMI of 30 kg/m^2^ or higher) at assessment was associated with a lower risk of premature ovarian insufficiency (HR, 0.36).
  - Survivors with premature ovarian insufficiency had increased odds of low bone mineral density (OR, 5.07) and frailty (OR, 3.5) than did those without premature ovarian insufficiency.
6. Limited data exist on ovarian function in high-risk neuroblastoma survivors. A retrospective review included 83 female survivors of high-risk neuroblastoma (median age, 19 years; median follow-up, 15 years) who were 5 years or more from diagnosis and followed in a tertiary cancer center. Ovarian dysfunction was reported, particularly after autologous stem cell rescue.[60]
  - Forty-nine survivors (59%) had ovarian dysfunction, and 34 survivors (41%) developed premature ovarian insufficiency. Ovarian dysfunction was defined as FSH levels of >15 mU/mL, and premature ovarian insufficiency was defined as persistent ovarian dysfunction requiring hormone replacement therapy.
  - Survivors treated with autologous stem cell rescue (n = 51) were 3.2-fold more likely to develop ovarian dysfunction (P < .001) and 4.5-fold more likely to develop premature ovarian insufficiency (P = .002), compared with those treated with conventional chemotherapy (n = 32), after adjusting for attained age.
  - Two survivors in the nonautologous stem cell rescue group and six in the autologous stem cell rescue group achieved at least one spontaneous pregnancy.

#### Ovarian function after HSCT

The preservation of ovarian function among women treated with HSCT is related to age at treatment, receipt of pretransplant alkylating agent chemotherapy and abdominal-pelvic radiation therapy, and transplant conditioning regimen.[52,61]

Evidence (excess risk of premature ovarian insufficiency after HSCT):

1. A retrospective observational study included 178 women survivors of childhood leukemia from the long-term French follow-up program. The study examined women who were prepubertal when they underwent an HSCT for acute leukemia. Among these survivors, 116 had received TBI and 62 had received a busulfan-based conditioning protocol. The median follow-up from HSCT was 18 years.[62]
  - Among 178 women, 106 (60%) needed pubertal induction (with hormone substitution treatment), whereas 72 (40%) had spontaneous menarche.
  - After spontaneous menarche, 33 patients (46%) developed premature ovarian insufficiency, mostly within 5 years of HSCT.
  - Risk factors for developing premature ovarian insufficiency were older age at the time of HSCT and cryopreservation of ovarian tissue.
  - In patients who underwent HSCT before the age of 4.8 years, more than 65% had spontaneous menarche, and almost 50% did not have premature ovarian insufficiency.
  - In patients who underwent HSCT after the age of 10.9 years, more than 85% did not have spontaneous menarche and needed induction of puberty (with hormone replacement therapy).
2. Girls and young women conditioned with TBI or busulfan-based regimens appear to be at equally high risk of declining ovarian function and premature menopause compared with patients conditioned with cyclophosphamide only.[52] All women who received high-dose (50 mg/kg/day × 4 days) cyclophosphamide before HSCT for aplastic anemia developed amenorrhea after transplant.
3. In another series, 36 of 43 women with aplastic anemia conditioned with cyclophosphamide (200 mg/kg) had recovery of normal ovarian function 3 to 42 months after transplant, including all of the 27 patients who were between ages 13 and 25 years at the time of HSCT.[53]
4. TBI is especially damaging when given in a single fraction.[52] Most postpubertal women who receive TBI before HSCT develop amenorrhea.
5. In one series, recovery of normal ovarian function occurred in only 9 of 144 patients and was highly correlated with age at time of radiation therapy in patients younger than 25 years.[53]
6. Among women with leukemia, cranial irradiation before transplant further decreased the possibility of retaining ovarian function.[52]
7. Ovarian function may be better preserved (based on pubertal progress and gonadotropin levels) in females undergoing HSCT with reduced-intensity conditioning using fludarabine/melphalan than in those undergoing conditioning with myeloablative busulfan/cyclophosphamide.[41]

#### Predicting premature ovarian failure

1. Using data from the CCSS, investigators developed treatment-informed prediction models to estimate survivors' risks of developing primary ovarian insufficiency. These models provide patient-specific risk across the reproductive age spectrum. Previous models were used to estimate the survivors' risks of developing acute ovarian failure within 5 years of cancer diagnosis.[63] Information from these models can inform discussions surrounding the choice and timing of therapies to preserve fertility. The SJLIFE cohort was used to validate the first age-specific risk prediction models for primary ovarian insufficiency. There were 7,891 female CCSS survivors (922 with primary ovarian insufficiency) included in the development of the primary ovarian insufficiency risk prediction model and 1,349 female SJLIFE survivors (101 with primary ovarian insufficiency) included in the external validation study.[64]
  - The estimated primary ovarian insufficiency prevalence increased from 7.9% to 18.6% in the CCSS and 7.3% to 14.9% in the SJLIFE as survivors aged from 21 to 40 years. In patients who developed primary ovarian insufficiency, 531 of 922 (57.6%) in the CCSS and 50 of 101 (49.5%) in the SJLIFE had acute ovarian failure.
  - The previous risk prediction model (that was limited to the period within 5 years of childhood cancer) was not useful for survivors whose menses resumed after treatment but had increased residual premature menopause risk by the time they were ready to have children. This study addressed this gap.
  - This comprehensive model incorporated cumulative prescribed or delivered doses of abdominal and/or pelvic radiation therapy, HSCT information, and a range of chemotherapy agents, especially individual alkylators. The model worked well for both cohorts of survivors.
  - This study evaluated genetic predictors, specifically a polygenic risk score consisting of genetic variants associated with treatment-related primary ovarian insufficiency in survivors.
  - The online calculator is available on the CCSS website (https://ccss.stjude.org/tools-documents/calculators-other-tools/ccss-ovarian-risk-calculator.html).
2. A multicenter Dutch study evaluated treatment-related factors associated with abnormal hormonal and ultrasound markers of ovarian reserve in 5-year female childhood cancer survivors (diagnosed between 1963 and 2002) and in controls. There were 564 survivors and 390 controls who underwent clinical assessments of ovarian reserve, including antimüllerian hormone (AMH), FSH, inhibin B levels, and antral follicle counts (AFC).[65]
  - Of the childhood cancer survivors, 7.0% to 17.7% had abnormal ovarian reserve markers, compared with 2.4% to 13.6% of controls.
  - Significantly more childhood cancer survivors older than 35 years had abnormal ovarian reserve markers than did controls (AMH: 26% vs. 4%; AFC: 20% vs. 3%; inhibin B: 42% vs. 16%). AMH and FSH were also significantly different in survivors younger than 35 years.
  - Treatments independently associated with at least one abnormal ovarian reserve marker included cyclophosphamide, procarbazine, a group of other alkylating agents, dactinomycin, doxorubicin, mitoxantrone, spinal radiation therapy, abdominal/pelvic radiation therapy, and TBI.
  - Dose-effect relationships could only be established for procarbazine and abdominal/pelvic radiation therapy.

### Fertility

Infertility remains one of the most common life-altering treatment effects experienced by long-term survivors of childhood cancer. Pediatric cancer cohort studies have demonstrated the impact of cytotoxic therapy on reproductive outcomes. CCSS investigations have elucidated factors contributing to subfertility among childhood cancer survivors.[66,67]

No abnormalities in fertility (reproductive characteristics and AMH levels as compared with controls) were identified in a series of 56 long-term female survivors of childhood differentiated thyroid cancer who received iodine I 131 (131I) for treatment. The median follow-up was 15.4 years (range, 8.3–24.7 years), and the median cumulative dose of 131I was 7.4 GBq/200.0 mCi. None of the survivors reported premature menopause.[68]

Evidence (excess risk of impaired fertility):

1. Fertility was evaluated in 10,938 CCSS participants (5,640 males, 5,298 females) and 3,949 siblings.[66]
  - At a median follow-up of 8 years from cohort entry, 38% of survivors reported having or siring a pregnancy, resulting in at least one live birth in 83% of those survivors.
  - Among siblings monitored for a median of 10 years, 62% reported having or siring a pregnancy, resulting in at least one live birth in 90% of those siblings.
  - Multivariable analysis confirmed that survivors had significantly decreased likelihood of siring or having a pregnancy (hazard ratio [HR], 0.63 in males and 0.87 in females) or of having a live birth (HR, 0.63 in males and 0.82 in females) than did siblings.
  - Greater doses of alkylating drugs (HR, 0.82 per 5,000 mg/m^2^ increments) and cisplatin reduced the likelihood of siring pregnancy among male survivors, but only busulfan and higher doses (>411 mg/m^2^) of lomustine significantly reduced pregnancy among females.
  - The risk of reduced likelihood of pregnancy in women was observed only at the highest cyclophosphamide equivalent dose (HR, 0.85 for upper quartile [≥11,295 mg/m^2^] vs. no exposure).
  - HRs (95% CIs) for the likelihood of reporting first pregnancy by cyclophosphamide equivalent dose for male and female survivors are summarized in Table 16:
    Table 16. Cyclophosphamide Equivalent Dose by Tertile and Sex
    Cyclophosphamide Equivalent Dose by Tertile | Male | | Female
    | HR (95% CI) | P Value | HR (95% CI) | P Value
    Lower (<4,897 mg/m^2^) | 1.14 (1.00–1.30) | .045 | 0.97 (0.86–1.08) | .55
    Middle (4,897–9,638 mg/m^2^) | 0.79 (0.68–0.91) | .0010 | 0.98 (0.87–1.11) | .76
    Upper (≥9,639 mg/m^2^) | 0.55 (0.47–0.64) | <.0001 | 0.90 (0.79–1.01) | .07
    CI = confidence interval; HR = hazard ratio.
  - Similar relationships were observed for live birth outcomes.
2. Fertility may be impaired by factors other than the absence of sperm and ova. Conception requires delivery of sperm to the uterine cervix, patency of the fallopian tubes for fertilization to occur, and appropriate conditions in the uterus for implantation.
  - Retrograde ejaculation occurs with a significant frequency in men who undergo bilateral retroperitoneal lymph node dissection.[8,9]
  - Uterine structure may be affected by abdominal irradiation. A study demonstrated that uterine length was significantly shorter in ten women with ovarian failure who had been treated with whole-abdomen irradiation. Endometrial thickness did not increase in response to hormone replacement therapy in three women who underwent weekly ultrasonography examinations. Using Doppler ultrasonography, no blood flow was detectable through either uterine artery in five women, and through one uterine artery in three additional women.[69]
3. In a study of menopausal status on reproductive outcomes in 2,930 survivors from the CCSS, investigators found that for those who ultimately developed nonsurgical premature menopause, rates of pregnancy and live birth were substantially reduced before nonsurgical premature menopause between the ages of 31 and 40 years. However, pregnancy and live birth rates did not differ for those aged 21 to 30 years on the basis of ultimate menopausal status.[54]
  - Treatment variables significant for developing nonsurgical premature menopause by multivariable analyses included exposure to procarbazine doses higher than 4,000 mg/m^2^, any ovarian irradiation, and HSCT.
  - A cyclophosphamide equivalent dose of 6,000 mg/m^2^ or higher that included procarbazine was significant in the univariate analysis, but it did not achieve significance in the multivariable analysis.

### Sexual Function

The psychosexual health of adults who were treated for cancer during childhood, adolescence, and young adulthood has not been well studied.

An SJLIFE study estimated the prevalence of and risk factors for sexual dysfunction among 936 adult female survivors of childhood cancer. The study also evaluated associations between sexual dysfunction and psychological symptoms/quality of life.[70]

- Sexual dysfunction was prevalent in almost 20% of survivors. Survivors of germ cell tumors (OR, 8.8), renal tumors, (OR, 4.5) or leukemia (OR, 3.1) were at greater risk than controls.
- Older age at follow-up (45–54 vs. 18–24 years; OR, 5.7) and history of pelvic surgery (OR, 2.0), depression (OR, 2.0), and hypogonadism receiving hormone replacement (OR, 3.3) were associated with sexual dysfunction.
- Only 2.9% of survivors with sexual dysfunction reported receiving intervention.

In a prospective cohort study (Project REACH), 249 adult childhood cancer survivors (aged 18–65 years) completed measures for physical activity and mental health, including sexual dysfunction. Thirty-two percent of survivors experienced clinically significant sexual dysfunction. Physical and mental health concerns such as fatigue, poor sleep, pain, poor physical health, poor mental health, and depression were associated with sexual dysfunction and a history of a CNS tumor.[71]

### Reproduction

#### Fertility preservation

Progress in reproductive endocrinology has resulted in the availability of several options for preserving or permitting fertility in patients about to receive potentially toxic chemotherapy or radiation therapy.[72-75]

- For males, cryopreservation of spermatozoa before treatment is an effective method to circumvent the sterilizing effect of therapy for all peripubertal and postpubertal males. Although pretreatment semen quality in patients with cancer has been shown to be less than that noted in healthy donors, the percentage decline in semen quality and the effect of cryodamage to spermatozoa from patients with cancer is similar to that of normal donors.[76,77]
- For males unable to bank sperm, newer technologies such as testicular sperm extraction may be an option. Further micromanipulative technological advances such as intracytoplasmic sperm injection and similar techniques may be able to render sperm extracted surgically, or even poor-quality cryopreserved spermatozoa from cancer patients, capable of successful fertilization.[78,79]
  - Based on Norway national registries (Cancer Registry of Norway and Medical Birth Registry), young male cancer survivors were reported to be at a threefold increased risk of using assisted reproduction technology for offspring conception.[80]
  - In a population-based nationwide study using the Swedish Medical Birth Registry, childhood cancer survivors and teenage and young adult cancer survivors were more likely to achieve paternity through intracytoplasmic sperm injection rather than in vitro fertilization.[81]
- For females, the most successful assisted-reproductive techniques depend on harvesting and banking the postpubertal patient’s oocytes and cryopreserving unfertilized oocytes or embryos before gonadotoxic therapy.[82]
- Established options for females include ovarian transposition, shielding from radiation, and oocyte/embryo cryopreservation. Ovarian tissue cryopreservation is currently considered experimental in the United States, but it is performed as an established fertility preservation procedure in parts of Europe and Israel.[83,84] Options for prepubertal female patients are limited to investigational ovarian tissue cryopreservation for later autotransplant, which may be offered to girls with nonovarian, nonhematologic cancers.[85]
- Gonadotropin-releasing hormone agonists are used for ovarian suppression but are considered experimental, and their effectiveness is unproven.[86] Several randomized trials and meta-analyses have explored the benefits of gonadotropin-releasing hormone analogues during chemotherapy. However, the use of such analogues for ovarian protection during chemotherapy remains controversial. Two randomized controlled trials demonstrated that menstrual function, ovulation, and pregnancy were more likely to occur in patients with breast cancer after treatment with gonadotropin-releasing hormone agonists during chemotherapy, compared with those who did not receive this therapy. However, benefits for fertility outcomes are lacking. Studies have been limited by inadequate follow-up and the assessment of surrogate measures of fertility rather than pregnancy rates. While gonadotropin-releasing hormone analogues are not currently approved by the U.S. Food and Drug Administration for fertility preservation, these medications may be used off label.[87]

#### Risk of pregnancy complications

For survivors who maintain fertility, numerous investigations have evaluated the prevalence of and risk factors for pregnancy complications in adults treated for cancer during childhood. Pregnancy complications such as hypertension, fetal malposition, fetal loss/spontaneous abortion, preterm labor, and low birth weight have been observed in association with specific diagnostic and treatment groups.[88-93]

Evidence (excess risk of pregnancy complications):

1. In a study of 4,029 pregnancies among 1,915 women monitored in the CCSS, there were 63% live births, 1% stillbirths, 15% miscarriages, 17% abortions, and 3% unknown or in gestation.[88]
  - Risk of miscarriage was 3.6-fold higher in women treated with craniospinal irradiation and 1.7-fold higher in those treated with pelvic irradiation. Chemotherapy exposure alone did not increase risk of miscarriage.
  - Survivors were less likely to have live births, more likely to have medical abortions, and more likely to have low-birth-weight babies than were siblings.
2. Disruption of normal uterine function after radiation therapy or other treatment that results in reduced uterine volume and impaired uterine blood flow appears to be the underlying pathophysiology for many of these adverse obstetrical events.[94,95]
3. In the National Wilms Tumor Study, records were obtained for 1,021 pregnancies of more than 20 weeks duration. In this group, there were 955 single live births.[96]
  - Hypertension complicating pregnancy, early or threatened labor, malposition of the fetus, lower birth weight (<2,500 g), and premature delivery (<36 weeks) were more frequent among women who had received flank irradiation, in a dose-dependent manner.
4. Another CCSS study evaluated pregnancy outcomes of partners of male survivors.[89]
  - Among 4,106 sexually active males, 1,227 reported they sired 2,323 pregnancies, which resulted in 69% live births, 13% miscarriages, 13% abortions, and 5% unknown or in gestation at the time of analysis.
  - Compared with partners of male siblings, there was a decreased incidence of live births (RR, 0.77), but no significant differences of pregnancy outcome by treatment.
5. Results from a Danish study confirm the association of uterine irradiation with spontaneous abortion, but not other types of abortion. In the Danish Cancer Registry, more than 34,000 pregnancies were evaluated, including 1,479 pregnancies in 1,688 female survivors of childhood cancer. The pregnancy outcomes of survivors, 2,737 sisters, and 16,700 comparison women in the population were identified.[90]
  - No significant differences were seen between survivors and comparison women in the proportions of live births, stillbirths, or all types of abortions combined.
  - Survivors with a history of neuroendocrine or abdominal radiation therapy had an increased risk of spontaneous abortion.
  - The pregnancy outcomes of survivors were similar to those of comparison women, with the exception of spontaneous abortion.
6. In a retrospective cohort analysis from the CCSS of 1,148 men and 1,657 women who had survived cancer, there were 4,946 pregnancies.[91]
  - Irradiation of the testes in men and pituitary gland in women and chemotherapy with alkylating drugs were not associated with an increased risk of stillbirth or neonatal death.
  - Uterine and ovarian irradiation at doses higher than 10 Gy significantly increased the risk of stillbirth and neonatal death.
  - For girls treated before menarche, irradiation of the uterus and ovaries at doses as low as 1 to 2.49 Gy significantly increased the risk of stillbirth or neonatal death.
7. Most pregnancies reported by survivors who underwent HSCT and their partners result in live births.[92]
  - In female HSCT survivors who were exposed to TBI, there appears to be an increased risk of preterm delivery of low-birth-weight infants.
  - Female HSCT survivors are at higher risk of needing cesarean delivery than are the normal population (42% vs. 16%).
8. A retrospective observational study included 178 women survivors of childhood leukemia from the long-term French follow-up program. The study examined women who had undergone prepubertal HSCT for acute leukemia. Among these survivors, 116 had received TBI and 62 had received a busulfan-based conditioning protocol. The median follow-up from HSCT was 18 years.[62]
  - In this cohort, 22 women (12%) had at least one spontaneous pregnancy, for a total of 37. Of the 37 pregnancies, there were 17 live births, 14 miscarriages, 4 legal abortions, and 2 therapeutic abortions.
  - Women who had not experienced premature ovarian insufficiency had better chances of spontaneous pregnancy than women who had immediate or secondary premature ovarian insufficiency.
9. Preservation of fertility and successful pregnancies may occur after HSCT, although the conditioning regimens that include TBI, cyclophosphamide, and busulfan are highly gonadotoxic. One study evaluated pregnancy outcomes in a group of females treated with HSCT.[97]
  - Among 708 women who were postpubertal at the time of transplant, 116 regained normal ovarian function and 32 became pregnant.
  - Among 82 women who were prepubertal at the time of transplant, 23 had normal ovarian function and nine became pregnant.
  - Of the 72 pregnancies in these 41 women, 16 occurred in those treated with TBI and 50% resulted in early termination.
  - Among the 56 pregnancies in women treated with cyclophosphamide without either TBI or busulfan, 21% resulted in early termination.
  - There were no pregnancies among the 73 women treated with busulfan and cyclophosphamide, and only one woman retained ovarian function.
10. A German Pediatric Oncology Group study demonstrated that the rate of childbearing for female survivors of Hodgkin lymphoma was similar to that of the general population. However, the rate of childbearing was lower for survivors who received pelvic radiation therapy.[98]
11. British CCSS investigators evaluated pregnancy and labor complications among female survivors of childhood cancer treated with abdominal radiation. The study linked British CCSS cohort data to a national hospital registry.[99]
  - Survivors treated with abdominal radiation had a significantly higher risk (RR, 2.1) of pregnancy complications than did survivors who did not receive abdominal radiation.
  - Risks were elevated for hypertension complicating pregnancy among Wilms tumor survivors (RR, 3.29) treated with abdominal radiation. Risks were also elevated for gestational diabetes mellitus (RR, 3.35) and anemia (RR, 2.10) among all survivors treated with abdominal radiation.
12. A systematic review compared the data from published pregnancy and child health outcomes for pediatric and young adult leukemia and lymphoma survivors with the data from controls who did not have a history of cancer.[100]
  - Compared with controls, survivors did not experience higher risks of spontaneous abortions, maternal diabetes and anemia, stillbirth, birth defects, or childhood cancer in offspring.
  - Compared with controls, survivors had lower live birth rates and modestly higher risks of preterm birth and low birth weight.
13. One study reviewed the effects of radiation therapy to the abdomen (partial or whole abdomen) on pregnancy and pregnancy outcomes in patients with a history of Wilms tumor. There were 1,021 pregnancies (with a duration of 20 weeks or longer), including 955 live births, from which there were 700 sets of maternal and offspring medical records.[96]
  - Female survivors of Wilms tumor who received radiation therapy are at an increased risk of hypertension complicating pregnancy, early or threatened labor, and fetal malposition.
  - The offspring of these patients were more likely to be premature and have low birth weights.

##### Female survivors of AYA cancers

The largest study to comprehensively investigate birth rates and obstetric complications in female survivors of AYA cancer and report a wide spectrum of obstetric outcomes for specific types of cancer was conducted using the Teenage Young Adult Cancer Survivor Study (TYACSS). The study included over 200,945 5-year survivors of cancer, diagnosed at age 15 to 39 years, from England and Wales. Investigators quantified deficits in birth rates and risks of obstetric complications for female survivors (n = 13,886) of 17 specific types of AYA cancer.[93]

- Survivors had 68% of the births expected in the general population. Survivors of other genitourinary cancers (other than cervix, ovary, bladder, or kidney), cervical cancer, and breast cancer had less than 50% of the expected births. Survivors of leukemia had 53% of the expected births.
- Survivors of cervical cancer were at risk of a spectrum of obstetric complications, including malpresentation of fetus, obstructed labor, amniotic fluid and membrane disorders, premature rupture of membranes, preterm birth, placental disorders such as placenta previa, and antepartum hemorrhage.
- Survivors of leukemia were at risk of preterm delivery, obstructed labor, postpartum hemorrhage, and retained placenta.
- Survivors of all other specific cancers had no more than two obstetric complications that exceeded an observed-to-expected ratio of 1.25 or greater.
- Based on these data, investigators suggested that survivors of cervical cancer and leukemia should be considered at high risk of obstetric complications, whereas survivors of other types of AYA cancer should be reassured concerning this risk.

#### Offspring of childhood cancer survivors

For childhood cancer survivors who have offspring, there is concern about congenital anomalies, genetic disease, or risk of cancer in the offspring. Children of cancer survivors are not at significantly increased risk of congenital anomalies stemming from their parents' exposure to mutagenic cancer treatments.

Evidence (children of cancer survivors not at significantly increased risk of congenital anomalies):

1. A retrospective cohort analysis of validated cases of congenital anomalies among 4,699 children of 1,128 male and 1,627 female participants of the CCSS observed the following:[101]
  - No significant associations between gonadal radiation therapy or cumulative exposure to alkylating agents and congenital anomalies in offspring.
2. A study compared 2,198 offspring of adult survivors treated for childhood cancer between 1945 and 1975 with 4,544 offspring of sibling controls.[102]
  - There were no differences in the proportion of offspring with cytogenetic syndromes, single-gene defects, or simple malformations.
  - There was similarly no effect of type of childhood cancer treatment on the occurrence of genetic disease in the offspring.
3. A population-based study compared 2,630 live-born offspring of childhood cancer survivors with 5,504 live-born offspring of the survivors' siblings.[103]
  - The study found no differences in proportion of abnormal karyotypes or incidence of Down syndrome or Turner syndrome between survivor and sibling offspring.
  - In the same population-based cohort, survivors treated with abdominal radiation therapy and/or alkylating agents did not have an increased risk of offspring with genetic disease, compared with survivors not exposed to these agents.
4. One study evaluated 5,847 offspring of survivors of childhood cancers treated in five Scandinavian countries.[104]
  - In the absence of a hereditary cancer syndrome (such as hereditary retinoblastoma), there was no increased risk of cancer in offspring.
  - Compared with the offspring of siblings, there was no excess risk of single-gene disorders, congenital malformations, or chromosomal syndromes among the offspring of former patients.[105]
5. A European Group for Blood and Marrow Transplantation study evaluated pregnancy outcomes in 19,412 patients who underwent allogeneic transplant and 17,950 patients who underwent autologous transplant.[92]
  - Investigators did not observe an increased risk of birth defects, developmental delay, or cancer among offspring of male and female HSCT recipients.
6. A nationwide Finnish population-based registry study compared the risk of congenital anomalies in the offspring of 6,862 long-term survivors of childhood, adolescent, and young adult cancer treated between 1953 and 2004 with the risk of congenital anomalies in the offspring of 35,690 siblings.[106]
  - Compared with siblings, childhood and adolescent survivors (prevalence ratio [PR], 1.17; 95% CI, 0.92–1.49) and young adult survivors (PR, 1.17; 95% CI, 0.83–1.23) were not at significant excess risk of congenital anomalies.
  - There was an association between parent cancer and congenital anomalies in the offspring of survivors who were diagnosed in the earlier decades (1955–1964: PR, 2.77; 95% CI, 1.26–6.11; and 1965–1974: PR, 1.55; 95% CI, 0.94–2.56).

Table 17 summarizes reproductive late effects and the related health screenings.

Table 17. Reproductive Late Effects^a^

Predisposing Therapy | Reproductive Late Effects | Health Screening
Alkylating agents; radiation exposing the gonads | Testicular hormonal dysfunction: Testosterone deficiency/insufficiency; delayed/arrested puberty | Tanner stage
Alkylating agents; radiation exposing the gonads | Testicular hormonal dysfunction: Testosterone deficiency/insufficiency; delayed/arrested puberty | Morning testosterone
Alkylating agents; radiation exposing the gonads | Testicular hormonal dysfunction: Testosterone deficiency/insufficiency; delayed/arrested puberty | LH
Alkylating agents; radiation exposing the gonads | Impaired spermatogenesis: Reduced fertility; oligospermia; azoospermia; infertility | Semen analysis
Alkylating agents; radiation exposing the gonads | Impaired spermatogenesis: Reduced fertility; oligospermia; azoospermia; infertility | FSH
Alkylating agents; radiation exposing the gonads | Impaired spermatogenesis: Reduced fertility; oligospermia; azoospermia; infertility | Inhibin B
Alkylating agents; radiation exposing the gonads | Ovarian hormone deficiencies: Delayed/arrested puberty; premature ovarian insufficiency/premature menopause. Reduced ovarian follicular pool: Diminished ovarian reserve; infertility. | Tanner stage
Alkylating agents; radiation exposing the gonads | Ovarian hormone deficiencies: Delayed/arrested puberty; premature ovarian insufficiency/premature menopause. Reduced ovarian follicular pool: Diminished ovarian reserve; infertility. | Menstrual cycle history
Alkylating agents; radiation exposing the gonads | Ovarian hormone deficiencies: Delayed/arrested puberty; premature ovarian insufficiency/premature menopause. Reduced ovarian follicular pool: Diminished ovarian reserve; infertility. | Estradiol
Alkylating agents; radiation exposing the gonads | Ovarian hormone deficiencies: Delayed/arrested puberty; premature ovarian insufficiency/premature menopause. Reduced ovarian follicular pool: Diminished ovarian reserve; infertility. | FSH
Alkylating agents; radiation exposing the gonads | Ovarian hormone deficiencies: Delayed/arrested puberty; premature ovarian insufficiency/premature menopause. Reduced ovarian follicular pool: Diminished ovarian reserve; infertility. | LH
Alkylating agents; radiation exposing the gonads | Ovarian hormone deficiencies: Delayed/arrested puberty; premature ovarian insufficiency/premature menopause. Reduced ovarian follicular pool: Diminished ovarian reserve; infertility. | AMH
Alkylating agents; radiation exposing the gonads | Ovarian hormone deficiencies: Delayed/arrested puberty; premature ovarian insufficiency/premature menopause. Reduced ovarian follicular pool: Diminished ovarian reserve; infertility. | Antral follicle count

AMH = antimüllerian hormone; FSH = follicle-stimulating hormone; LH = luteinizing hormone.

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

For reproductive late effects information, including risk factors, evaluation, and health counseling, see the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### References

van Dorp W, Mulder RL, Kremer LC, et al.: Recommendations for Premature Ovarian Insufficiency Surveillance for Female Survivors of Childhood, Adolescent, and Young Adult Cancer: A Report From the International Late Effects of Childhood Cancer Guideline Harmonization Group in Collaboration With the PanCareSurFup Consortium. J Clin Oncol 34 (28): 3440-50, 2016.27458300
Skinner R, Mulder RL, Kremer LC, et al.: Recommendations for gonadotoxicity surveillance in male childhood, adolescent, and young adult cancer survivors: a report from the International Late Effects of Childhood Cancer Guideline Harmonization Group in collaboration with the PanCareSurFup Consortium. Lancet Oncol 18 (2): e75-e90, 2017.28214419
Green DM, Nolan VG, Goodman PJ, et al.: The cyclophosphamide equivalent dose as an approach for quantifying alkylating agent exposure: a report from the Childhood Cancer Survivor Study. Pediatr Blood Cancer 61 (1): 53-67, 2014.23940101
Merchant TE, Wu S, Onar-Thomas A, et al.: Hypogonadism After Treatment for Medulloblastoma: Results From the SJMB03 Trial of Risk-Adapted Radiation Therapy. Int J Radiat Oncol Biol Phys 116 (3): 569-578, 2023.36641041
Lehmann V, Chemaitilly W, Lu L, et al.: Gonadal Functioning and Perceptions of Infertility Risk Among Adult Survivors of Childhood Cancer: A Report From the St Jude Lifetime Cohort Study. J Clin Oncol 37 (11): 893-902, 2019.30811296
Arap MA, Vicentini FC, Cocuzza M, et al.: Late hormonal levels, semen parameters, and presence of antisperm antibodies in patients treated for testicular torsion. J Androl 28 (4): 528-32, 2007 Jul-Aug.17287456
Tryfonas G, Violaki A, Tsikopoulos G, et al.: Late postoperative results in males treated for testicular torsion during childhood. J Pediatr Surg 29 (4): 553-6, 1994.8014814
Narayan P, Lange PH, Fraley EE: Ejaculation and fertility after extended retroperitoneal lymph node dissection for testicular cancer. J Urol 127 (4): 685-8, 1982.7069831
Nijman JM, Jager S, Boer PW, et al.: The treatment of ejaculation disorders after retroperitoneal lymph node dissection. Cancer 50 (12): 2967-71, 1982.7139590
Fankhauser CD, Afferi L, Stroup SP, et al.: Minimally invasive retroperitoneal lymph node dissection for men with testis cancer: a retrospective cohort study of safety and feasibility. World J Urol 40 (6): 1505-1512, 2022.35279732
Schlegel PN, Walsh PC: Neuroanatomical approach to radical cystoprostatectomy with preservation of sexual function. J Urol 138 (6): 1402-6, 1987.3682067
Frees S, Rubenwolf P, Ziesel C, et al.: Erectile function after treatment for rhabdomyosarcoma of prostate and bladder. J Pediatr Urol 12 (6): 404.e1-404.e6, 2016.27570092
Hahn EW, Feingold SM, Simpson L, et al.: Recovery from aspermia induced by low-dose radiation in seminoma patients. Cancer 50 (2): 337-40, 1982.7083140
Blatt J, Sherins RJ, Niebrugge D, et al.: Leydig cell function in boys following treatment for testicular relapse of acute lymphoblastic leukemia. J Clin Oncol 3 (9): 1227-31, 1985.3928829
Izard MA: Leydig cell function and radiation: a review of the literature. Radiother Oncol 34 (1): 1-8, 1995.7792393
Romerius P, Ståhl O, Moëll C, et al.: High risk of azoospermia in men treated for childhood cancer. Int J Androl 34 (1): 69-76, 2011.20345878
Shafford EA, Kingston JE, Malpas JS, et al.: Testicular function following the treatment of Hodgkin's disease in childhood. Br J Cancer 68 (6): 1199-204, 1993.8260374
Whitehead E, Shalet SM, Jones PH, et al.: Gonadal function after combination chemotherapy for Hodgkin's disease in childhood. Arch Dis Child 57 (4): 287-91, 1982.7082042
Aubier F, Flamant F, Brauner R, et al.: Male gonadal function after chemotherapy for solid tumors in childhood. J Clin Oncol 7 (3): 304-9, 1989.2493074
Jaffe N, Sullivan MP, Ried H, et al.: Male reproductive function in long-term survivors of childhood cancer. Med Pediatr Oncol 16 (4): 241-7, 1988.3138517
Pryzant RM, Meistrich ML, Wilson G, et al.: Long-term reduction in sperm count after chemotherapy with and without radiation therapy for non-Hodgkin's lymphomas. J Clin Oncol 11 (2): 239-47, 1993.8426200 93147855
Meistrich ML, Wilson G, Brown BW, et al.: Impact of cyclophosphamide on long-term reduction in sperm count in men treated with combination chemotherapy for Ewing and soft tissue sarcomas. Cancer 70 (11): 2703-12, 1992.1423201 93046048
Kenney LB, Laufer MR, Grant FD, et al.: High risk of infertility and long term gonadal damage in males treated with high dose cyclophosphamide for sarcoma during childhood. Cancer 91 (3): 613-21, 2001.11169946 21097522
Garolla A, Pizzato C, Ferlin A, et al.: Progress in the development of childhood cancer therapy. Reprod Toxicol 22 (2): 126-32, 2006.16781110
Williams D, Crofton PM, Levitt G: Does ifosfamide affect gonadal function? Pediatr Blood Cancer 50 (2): 347-51, 2008.17973323
Jahnukainen K, Heikkinen R, Henriksson M, et al.: Semen quality and fertility in adult long-term survivors of childhood acute lymphoblastic leukemia. Fertil Steril 96 (4): 837-42, 2011.21868007
Green DM, Liu W, Kutteh WH, et al.: Cumulative alkylating agent exposure and semen parameters in adult survivors of childhood cancer: a report from the St Jude Lifetime Cohort Study. Lancet Oncol 15 (11): 1215-23, 2014.25239573
Sanders JE, Buckner CD, Leonard JM, et al.: Late effects on gonadal function of cyclophosphamide, total-body irradiation, and marrow transplantation. Transplantation 36 (3): 252-5, 1983.6412404
Viviani S, Santoro A, Ragni G, et al.: Gonadal toxicity after combination chemotherapy for Hodgkin's disease. Comparative results of MOPP vs ABVD. Eur J Cancer Clin Oncol 21 (5): 601-5, 1985.2408897
Mackie EJ, Radford M, Shalet SM: Gonadal function following chemotherapy for childhood Hodgkin's disease. Med Pediatr Oncol 27 (2): 74-8, 1996.8649323
Sherins RJ, Olweny CL, Ziegler JL: Gynecomastia and gonadal dysfunction in adolescent boys treated with combination chemotherapy for Hodgkin's disease. N Engl J Med 299 (1): 12-6, 1978.661845
Dhabhar BN, Malhotra H, Joseph R, et al.: Gonadal function in prepubertal boys following treatment for Hodgkin's disease. Am J Pediatr Hematol Oncol 15 (3): 306-10, 1993.8328644 93319066
Heikens J, Behrendt H, Adriaanse R, et al.: Irreversible gonadal damage in male survivors of pediatric Hodgkin's disease. Cancer 78 (9): 2020-4, 1996.8909325 97065844
da Cunha MF, Meistrich ML, Fuller LM, et al.: Recovery of spermatogenesis after treatment for Hodgkin's disease: limiting dose of MOPP chemotherapy. J Clin Oncol 2 (6): 571-7, 1984.6547167
Brämswig JH, Heimes U, Heiermann E, et al.: The effects of different cumulative doses of chemotherapy on testicular function. Results in 75 patients treated for Hodgkin's disease during childhood or adolescence. Cancer 65 (6): 1298-302, 1990.2106384
Green DM, Zhu L, Wang M, et al.: Effect of cranial irradiation on sperm concentration of adult survivors of childhood acute lymphoblastic leukemia: a report from the St. Jude Lifetime Cohort Study†. Hum Reprod 32 (6): 1192-1201, 2017.28444255
Lopez R, Plat G, Bertrand Y, et al.: Testosterone deficiency in men surviving childhood acute leukemia after treatment with hematopoietic stem cell transplantation or testicular radiation: an L.E.A. study. Bone Marrow Transplant 56 (6): 1422-1425, 2021.33454725
Haavisto A, Lampic C, Wettergren L, et al.: Reproductive late effects and testosterone replacement therapy in male childhood cancer survivors: A population-based study (the Fex-Can study). Int J Cancer 154 (12): 2121-2131, 2024.38385825
Cattoni A, Nicolosi ML, Capitoli G, et al.: Pubertal attainment and Leydig cell function following pediatric hematopoietic stem cell transplantation: a three-decade longitudinal assessment. Front Endocrinol (Lausanne) 14: 1292683, 2023.38152128
Ishiguro H, Yasuda Y, Tomita Y, et al.: Gonadal shielding to irradiation is effective in protecting testicular growth and function in long-term survivors of bone marrow transplantation during childhood or adolescence. Bone Marrow Transplant 39 (8): 483-90, 2007.17334386
Panasiuk A, Nussey S, Veys P, et al.: Gonadal function and fertility after stem cell transplantation in childhood: comparison of a reduced intensity conditioning regimen containing melphalan with a myeloablative regimen containing busulfan. Br J Haematol 170 (5): 719-26, 2015.25974284
Green DM, Zhu L, Zhang N, et al.: Lack of specificity of plasma concentrations of inhibin B and follicle-stimulating hormone for identification of azoospermic survivors of childhood cancer: a report from the St Jude lifetime cohort study. J Clin Oncol 31 (10): 1324-8, 2013.23423746
van Dorp W, van der Geest IM, Laven JS, et al.: Gonadal function recovery in very long-term male survivors of childhood cancer. Eur J Cancer 49 (6): 1280-6, 2013.23298710
Chemaitilly W, Liu Q, van Iersel L, et al.: Leydig Cell Function in Male Survivors of Childhood Cancer: A Report From the St Jude Lifetime Cohort Study. J Clin Oncol 37 (32): 3018-3031, 2019.31557085
Park JY, Kim DY, Suh DS, et al.: Outcomes of pediatric and adolescent girls with malignant ovarian germ cell tumors. Gynecol Oncol 137 (3): 418-22, 2015.25842162
Wallace WH, Shalet SM, Crowne EC, et al.: Ovarian failure following abdominal irradiation in childhood: natural history and prognosis. Clin Oncol (R Coll Radiol) 1 (2): 75-9, 1989.2486484
Scott JE: Pubertal development in children treated for nephroblastoma. J Pediatr Surg 16 (2): 122-5, 1981.6264059
Hamre MR, Robison LL, Nesbit ME, et al.: Effects of radiation on ovarian function in long-term survivors of childhood acute lymphoblastic leukemia: a report from the Childrens Cancer Study Group. J Clin Oncol 5 (11): 1759-65, 1987.3119785 88061481
Wallace WH, Shalet SM, Tetlow LJ, et al.: Ovarian function following the treatment of childhood acute lymphoblastic leukaemia. Med Pediatr Oncol 21 (5): 333-9, 1993.8492747
Sklar CA, Mertens AC, Mitby P, et al.: Premature menopause in survivors of childhood cancer: a report from the childhood cancer survivor study. J Natl Cancer Inst 98 (13): 890-6, 2006.16818852
Chemaitilly W, Mertens AC, Mitby P, et al.: Acute ovarian failure in the childhood cancer survivor study. J Clin Endocrinol Metab 91 (5): 1723-8, 2006.16492690
Vatanen A, Wilhelmsson M, Borgström B, et al.: Ovarian function after allogeneic hematopoietic stem cell transplantation in childhood and adolescence. Eur J Endocrinol 170 (2): 211-8, 2014.24179099
Sanders JE, Buckner CD, Amos D, et al.: Ovarian function following marrow transplantation for aplastic anemia or leukemia. J Clin Oncol 6 (5): 813-8, 1988.3130466
Levine JM, Whitton JA, Ginsberg JP, et al.: Nonsurgical premature menopause and reproductive implications in survivors of childhood cancer: A report from the Childhood Cancer Survivor Study. Cancer 124 (5): 1044-1052, 2018.29338081
van den Berg MH, van Dijk M, Byrne J, et al.: Treatment-related fertility impairment in long-term female childhood, adolescent and young adult cancer survivors: investigating dose-effect relationships in a European case-control study (PanCareLIFE). Hum Reprod 36 (6): 1561-1573, 2021.33744927
van der Kaaij MA, Heutte N, Meijnders P, et al.: Premature ovarian failure and fertility in long-term survivors of Hodgkin's lymphoma: a European Organisation for Research and Treatment of Cancer Lymphoma Group and Groupe d'Etude des Lymphomes de l'Adulte Cohort Study. J Clin Oncol 30 (3): 291-9, 2012.22184372
Thomas-Teinturier C, El Fayech C, Oberlin O, et al.: Age at menopause and its influencing factors in a cohort of survivors of childhood cancer: earlier but rarely premature. Hum Reprod 28 (2): 488-95, 2013.23154067
Weil BR, Murphy AJ, Liu Q, et al.: Late Health Outcomes Among Survivors of Wilms Tumor Diagnosed Over Three Decades: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 41 (14): 2638-2650, 2023.36693221
Chemaitilly W, Li Z, Krasin MJ, et al.: Premature Ovarian Insufficiency in Childhood Cancer Survivors: A Report From the St. Jude Lifetime Cohort. J Clin Endocrinol Metab 102 (7): 2242-2250, 2017.28368472
Jimenez-Kurlander L, DeRosa A, Kostrzewa CE, et al.: Ovarian function in female survivors of high-risk neuroblastoma. Pediatr Blood Cancer 71 (9): e31181, 2024.38967225
Bresters D, Emons JA, Nuri N, et al.: Ovarian insufficiency and pubertal development after hematopoietic stem cell transplantation in childhood. Pediatr Blood Cancer 61 (11): 2048-53, 2014.25111958
Chabut M, Schneider P, Courbiere B, et al.: Ovarian Function and Spontaneous Pregnancy After Hematopoietic Stem Cell Transplantation for Leukemia Before Puberty: An L.E.A. Cohort Study. Transplant Cell Ther 29 (6): 378.e1-378.e9, 2023.36849077
Clark RA, Mostoufi-Moab S, Yasui Y, et al.: Predicting acute ovarian failure in female survivors of childhood cancer: a cohort study in the Childhood Cancer Survivor Study (CCSS) and the St Jude Lifetime Cohort (SJLIFE). Lancet Oncol 21 (3): 436-445, 2020.32066539
Im C, Lu Z, Mostoufi-Moab S, et al.: Development and validation of age-specific risk prediction models for primary ovarian insufficiency in long-term survivors of childhood cancer: a report from the Childhood Cancer Survivor Study and St Jude Lifetime Cohort. Lancet Oncol 24 (12): 1434-1442, 2023.37972608
van den Berg MH, Overbeek A, Lambalk CB, et al.: Long-term effects of childhood cancer treatment on hormonal and ultrasound markers of ovarian reserve. Hum Reprod 33 (8): 1474-1488, 2018.29982673
Chow EJ, Stratton KL, Leisenring WM, et al.: Pregnancy after chemotherapy in male and female survivors of childhood cancer treated between 1970 and 1999: a report from the Childhood Cancer Survivor Study cohort. Lancet Oncol 17 (5): 567-76, 2016.27020005
Armuand G, Skoog-Svanberg A, Bladh M, et al.: Reproductive Patterns Among Childhood and Adolescent Cancer Survivors in Sweden: A Population-Based Matched-Cohort Study. J Clin Oncol 35 (14): 1577-1583, 2017.28350518
Nies M, Cantineau AEP, Arts EGJM, et al.: Long-Term Effects of Radioiodine Treatment on Female Fertility in Survivors of Childhood Differentiated Thyroid Carcinoma. Thyroid 30 (8): 1169-1176, 2020.32079487
Critchley HO, Wallace WH, Shalet SM, et al.: Abdominal irradiation in childhood; the potential for pregnancy. Br J Obstet Gynaecol 99 (5): 392-4, 1992.1622911
Bjornard KL, Howell CR, Klosky JL, et al.: Psychosexual Functioning of Female Childhood Cancer Survivors: A Report From the St. Jude Lifetime Cohort Study. J Sex Med 17 (10): 1981-1994, 2020.32723681
Chevalier LL, McCormick K, Cooney TM, et al.: Sexual health in adult survivors of childhood cancer: A Project REACH study. Cancer 130 (17): 3023-3033, 2024.38804691
Loren AW, Mangu PB, Beck LN, et al.: Fertility preservation for patients with cancer: American Society of Clinical Oncology clinical practice guideline update. J Clin Oncol 31 (19): 2500-10, 2013.23715580
Mulder RL, Font-Gonzalez A, Hudson MM, et al.: Fertility preservation for female patients with childhood, adolescent, and young adult cancer: recommendations from the PanCareLIFE Consortium and the International Late Effects of Childhood Cancer Guideline Harmonization Group. Lancet Oncol 22 (2): e45-e56, 2021.33539753
Mulder RL, Font-Gonzalez A, Green DM, et al.: Fertility preservation for male patients with childhood, adolescent, and young adult cancer: recommendations from the PanCareLIFE Consortium and the International Late Effects of Childhood Cancer Guideline Harmonization Group. Lancet Oncol 22 (2): e57-e67, 2021.33539754
Mulder RL, Font-Gonzalez A, van Dulmen-den Broeder E, et al.: Communication and ethical considerations for fertility preservation for patients with childhood, adolescent, and young adult cancer: recommendations from the PanCareLIFE Consortium and the International Late Effects of Childhood Cancer Guideline Harmonization Group. Lancet Oncol 22 (2): e68-e80, 2021.33539755
Agarwa A: Semen banking in patients with cancer: 20-year experience. Int J Androl 23 (Suppl 2): 16-9, 2000.10849486 20309664
Müller J, Sønksen J, Sommer P, et al.: Cryopreservation of semen from pubertal boys with cancer. Med Pediatr Oncol 34 (3): 191-4, 2000.10696125 20160838
Dar S, Orvieto R, Levron J, et al.: IVF outcome in azoospermic cancer survivors. Eur J Obstet Gynecol Reprod Biol 220: 84-87, 2018.29179011
Borgmann-Staudt A, Michael S, Sommerhaeuser G, et al.: The Use of Assisted Reproductive Technology by European Childhood Cancer Survivors. Curr Oncol 29 (8): 5748-5762, 2022.36005191
Gunnes MW, Lie RT, Bjørge T, et al.: Reproduction and marriage among male survivors of cancer in childhood, adolescence and young adulthood: a national cohort study. Br J Cancer 114 (3): 348-56, 2016.26794280
Kitlinski M, Giwercman A, Elenkov A: Paternity through use of assisted reproduction technology in male adult and childhood cancer survivors: a nationwide register study. Hum Reprod 38 (5): 973-981, 2023.36773319
Domingo J, Ayllón Y, Domingo S, et al.: New approaches to female fertility preservation. Clin Transl Oncol 11 (3): 154-9, 2009.19293052
Meirow D, Ra'anani H, Shapira M, et al.: Transplantations of frozen-thawed ovarian tissue demonstrate high reproductive performance and the need to revise restrictive criteria. Fertil Steril 106 (2): 467-74, 2016.27181924
Pacheco F, Oktay K: Current Success and Efficiency of Autologous Ovarian Transplantation: A Meta-Analysis. Reprod Sci 24 (8): 1111-1120, 2017.28701069
Oktay K, Karlikaya G: Ovarian function after transplantation of frozen, banked autologous ovarian tissue. N Engl J Med 342 (25): 1919, 2000.10877641
Demeestere I, Brice P, Peccatori FA, et al.: No Evidence for the Benefit of Gonadotropin-Releasing Hormone Agonist in Preserving Ovarian Function and Fertility in Lymphoma Survivors Treated With Chemotherapy: Final Long-Term Report of a Prospective Randomized Trial. J Clin Oncol 34 (22): 2568-74, 2016.27217453
Practice Committee of the American Society for Reproductive Medicine. Electronic address: asrm@asrm.org: Fertility preservation in patients undergoing gonadotoxic therapy or gonadectomy: a committee opinion. Fertil Steril 112 (6): 1022-1033, 2019.31843073
Green DM, Kawashima T, Stovall M, et al.: Fertility of female survivors of childhood cancer: a report from the childhood cancer survivor study. J Clin Oncol 27 (16): 2677-85, 2009.19364965
Green DM, Kawashima T, Stovall M, et al.: Fertility of male survivors of childhood cancer: a report from the Childhood Cancer Survivor Study. J Clin Oncol 28 (2): 332-9, 2010.19949008
Winther JF, Boice JD, Svendsen AL, et al.: Spontaneous abortion in a Danish population-based cohort of childhood cancer survivors. J Clin Oncol 26 (26): 4340-6, 2008.18779621
Signorello LB, Mulvihill JJ, Green DM, et al.: Stillbirth and neonatal death in relation to radiation exposure before conception: a retrospective cohort study. Lancet 376 (9741): 624-30, 2010.20655585
Salooja N, Szydlo RM, Socie G, et al.: Pregnancy outcomes after peripheral blood or bone marrow transplantation: a retrospective survey. Lancet 358 (9278): 271-6, 2001.11498213
Sunguc C, Winter DL, Heymer EJ, et al.: Risks of adverse obstetric outcomes among female survivors of adolescent and young adult cancer in England (TYACSS): a population-based, retrospective cohort study. Lancet Oncol 25 (8): 1080-1091, 2024.38944050
Beneventi F, Locatelli E, Giorgiani G, et al.: Adolescent and adult uterine volume and uterine artery Doppler blood flow among subjects treated with bone marrow transplantation or chemotherapy in pediatric age: a case-control study. Fertil Steril 103 (2): 455-61, 2015.25497446
van de Loo LEXM, van den Berg MH, Overbeek A, et al.: Uterine function, pregnancy complications, and pregnancy outcomes among female childhood cancer survivors. Fertil Steril 111 (2): 372-380, 2019.30691634
Green DM, Lange JM, Peabody EM, et al.: Pregnancy outcome after treatment for Wilms tumor: a report from the national Wilms tumor long-term follow-up study. J Clin Oncol 28 (17): 2824-30, 2010.20458053
Sanders JE, Hawley J, Levy W, et al.: Pregnancies following high-dose cyclophosphamide with or without high-dose busulfan or total-body irradiation and bone marrow transplantation. Blood 87 (7): 3045-52, 1996.8639928 96220004
Brämswig JH, Riepenhausen M, Schellong G: Parenthood in adult female survivors treated for Hodgkin's lymphoma during childhood and adolescence: a prospective, longitudinal study. Lancet Oncol 16 (6): 667-75, 2015.25959806
Reulen RC, Bright CJ, Winter DL, et al.: Pregnancy and Labor Complications in Female Survivors of Childhood Cancer: The British Childhood Cancer Survivor Study. J Natl Cancer Inst 109 (11): , 2017.28419299
Shliakhtsitsava K, Romero SAD, Dewald SR, et al.: Pregnancy and child health outcomes in pediatric and young adult leukemia and lymphoma survivors: a systematic review. Leuk Lymphoma 59 (2): 381-397, 2018.28728448
Signorello LB, Mulvihill JJ, Green DM, et al.: Congenital anomalies in the children of cancer survivors: a report from the childhood cancer survivor study. J Clin Oncol 30 (3): 239-45, 2012.22162566
Winther JF, Boice JD, Mulvihill JJ, et al.: Chromosomal abnormalities among offspring of childhood-cancer survivors in Denmark: a population-based study. Am J Hum Genet 74 (6): 1282-5, 2004.15106125
Winther JF, Olsen JH, Wu H, et al.: Genetic disease in the children of Danish survivors of childhood and adolescent cancer. J Clin Oncol 30 (1): 27-33, 2012.22124106
Sankila R, Olsen JH, Anderson H, et al.: Risk of cancer among offspring of childhood-cancer survivors. Association of the Nordic Cancer Registries and the Nordic Society of Paediatric Haematology and Oncology. N Engl J Med 338 (19): 1339-44, 1998.9571253 98223106
Byrne J, Rasmussen SA, Steinhorn SC, et al.: Genetic disease in offspring of long-term survivors of childhood and adolescent cancer. Am J Hum Genet 62 (1): 45-52, 1998.9443870 98107936
Seppänen VI, Artama MS, Malila NK, et al.: Risk for congenital anomalies in offspring of childhood, adolescent and young adult cancer survivors. Int J Cancer 139 (8): 1721-30, 2016.27280956

## Late Effects of the Respiratory System

Respiratory function may be compromised in long-term survivors of childhood cancer who were treated with the following therapies:

- Specific chemotherapeutic agents.
- Thoracic radiation therapy.
- Pulmonary/chest wall surgery.
- Hematopoietic stem cell transplant (HSCT).

The effects of early lung injury from cancer treatment may be exacerbated by the decline in lung function associated with normal aging, other comorbid chronic health conditions, or smoking. The quality of current evidence regarding this outcome is limited by retrospective data collection, small sample size, cohort selection and participation bias, description of outcomes following antiquated treatment approaches, and variability in time since treatment and method of ascertainment. No large cohort studies have been performed that include clinical evaluations coupled with functional and quality-of-life assessments.

The true prevalence or incidence of pulmonary dysfunction in childhood and adolescent cancer survivors is not clear. For children treated with HSCT, significant clinical disease has been observed. Population-based studies have demonstrated that survivors experience excess morbidity and mortality related to respiratory conditions.[1,2]

1. A study that linked population-based cancer registrations and inpatient admissions of 4,235 5-year childhood cancer survivors (aged 0–29 years) diagnosed between 1990 and 2011 compared admission rates of survivors with those of age- and sex-matched population controls.[1]
  - The cumulative incidence for any type of respiratory conditions was 49% by age 40 years among survivors, which was 1.86 (95% confidence interval [CI], 1.73–2.01) times higher than for controls.
  - Treatment with pulmonary toxic chemotherapy increased the risk of admission for all respiratory conditions (subdistribution hazard ratio (sHR), 1.26; 95% CI, 1.03–1.53) and pneumonia (sHR, 1.48; 95% CI, 1.01–2.17).
  - Subsequent mortality was highest in patients admitted for pneumonia compared with other respiratory conditions (28% vs. 15%, respectively).
2. Another population-based study investigated long-term respiratory mortality before age 40 years among 5-year cancer survivors participating in the British Childhood Cancer Survivor Study (BCCSS) and the Teenage and Young Adult Cancer Survivor Study (TYACSS).[2]
  - Excess respiratory deaths were observed among survivors in the BCCSS (standardized mortality ratio [SMR], 6.8; 95% CI, 5.8–7.9) and TYACSS (SMR, 1.7; 95% CI, 1.6–1.8), with risks varying by type of respiratory death (e.g., pneumonia, pneumonitis, fibrosis, and chronic lower respiratory disease).
  - Survivors of CNS tumors in the BCCSS and survivors of lung cancer, leukemia, and head and neck cancers in the TYACSS experienced the greatest number of excess respiratory deaths.
  - An increase in excess number of respiratory deaths was noted with increasing age, but reassuringly, a decline in excess deaths was observed among more recently diagnosed survivors in both cohorts.

Evidence (selected cohort studies describing long-term pulmonary function outcomes):

1. In a longitudinal study evaluating the magnitude and trajectory of pulmonary dysfunction among 121 childhood cancer survivors (median time from diagnosis to last evaluation, 17.1 years) treated with potentially pulmonary-toxic therapy (e.g., bleomycin, busulfan, pulmonary radiation therapy), survivors were significantly more likely to have restrictive and diffusion defects than were healthy controls.[3]
  - Age younger than 16 years at diagnosis and exposure to more than 20 Gy of chest radiation were associated with increased odds of restrictive defects, whereas female sex and chest radiation dose were associated with diffusion abnormalities.
  - Decline in pulmonary function over time was largely related to changes in diffusion capacity. The odds of decline in diffusion function over time showed a fourfold increase among females and 24-fold increase among survivors treated with more than 20 Gy of chest radiation. Compared with survivors with normal diffusion, those with diffusion defects were significantly more likely to be symptomatic and have poorer health-related quality-of-life scores, with decreases in the domains of physical functioning, role limitation because of physical health, and low energy/increased fatigue.
2. Childhood Cancer Survivor Study (CCSS) investigators compared self-reported pulmonary outcomes and their impact on daily activities among 5-year cancer survivors (n = 14,316; median, 25 years from diagnosis) and a sibling cohort (n = 4,027).[4]
  - Survivors were more likely to report chronic cough, the need for oxygen, lung fibrosis, and recurrent pneumonia than were siblings despite lower rates of smoking.
  - By age 45 years, the cumulative incidence of any pulmonary condition was 29.6% for survivors. Survivors with chronic pulmonary conditions (e.g., chronic cough) were more likely to report activity limitations than were those without these conditions.
  - Pulmonary complications contributed to an almost sixfold excess risk of death among survivors and demonstrated significant associations with exposure to platinum and lung radiation.
3. St. Jude Life (SJLIFE) cohort study investigators evaluated risk factors for clinically ascertained pulmonary function deficits and the functional impact of pulmonary impairment in 606 adult survivors of childhood cancer (median age, 34 years at evaluation; median time from cancer diagnosis, 21.9 years).[5]
  - Pulmonary function deficits were identified in the following:
    - Forced expiratory volume in one second (FEV_1_) less than 80% predicted (50.7% of patients).
    - Forced vital capacity (FVC) less than 80% predicted (47.2% of patients).
    - Single-breath diffusing capacity of the lung for carbon monoxide (DLCO) corrected for hemoglobin less than 75% predicted (44.6% of patients).
  - Obstructive lung defects (FEV_1_/FVC, <0.7) were found in 0.8% of patients and restrictive defects (total lung capacity [TLC] <75%) in 31.2% of patients.
  - Risk factors for abnormal pulmonary function included the following:
    - Estimated percentage of lung tissue that received at least 10 Gy of radiation therapy (V10) and elapsed time from diagnosis for FEV_1_.
    - Age at diagnosis and V10 for TLC.
    - Increased body mass index, V10, and elapsed time from diagnosis for DLCO corrected for hemoglobin.
  - Abnormal pulmonary function tests were associated with a decreased 6-minute walk distance.

### Respiratory Complications After Radiation Therapy

Radiation therapy that exposes the lung parenchyma can result in pulmonary dysfunction related to reduced lung volume, impaired dynamic compliance, and deformity of both the lung and chest wall.

- The potential for chronic pulmonary sequelae is related to the radiation dose administered, the volume of lung irradiated, and the fractional radiation therapy doses.[6]
- Combined-modality therapy, including radiation therapy and pulmonary toxic chemotherapy or thoracic/chest wall surgery, increases the risk of pulmonary function impairment.[7,8]
- Chronic pulmonary complications reported after treatment for pediatric malignancies include restrictive or obstructive chronic pulmonary disease, pulmonary fibrosis, and spontaneous pneumothorax.[9]

These sequelae are uncommon after contemporary therapy, which most often results in subclinical injury that is detected only by imaging or formal pulmonary function testing.

The Pediatric Normal Tissue Effects in the Clinic (PENTEC) pulmonary task force reviewed dosimetric and clinical factors to develop predictive models for radiation therapy–associated pulmonary toxicity in children.[10]

- After partial lung radiation, acute pulmonary toxicity was uncommon, with grade 2 to 3 incidence of radiation pneumonitis of less than 1%.
- Late toxicities, including subclinical/asymptomatic impaired pulmonary function, were more common (<4%) and appeared to increase in incidence and severity over time.
- The risk of pulmonary complications was low among children treated with a mean lung dose of lower than 14 Gy and total lung V_20Gy_ less than 30%.
- Within the spectrum of doses that could be analyzed, pulmonary toxicity was higher after whole-lung irradiation, but no dose-response relationship was identified.
- Bleomycin and other chemotherapeutic agents at current dose regimens did not contribute substantially to adverse pulmonary outcomes after partial lung irradiation. However, this risk increased with whole-lung irradiation.

Evidence (selected cohort studies describing pulmonary outcomes):

1. For survivors of pediatric Hodgkin lymphoma, the prevalence of pulmonary symptoms using contemporary involved-field techniques is reported to be low. However, some patients exhibit substantial subclinical dysfunction.[11]
  a. A study of 54 children who were treated with induction chemotherapy (usually doxorubicin, bleomycin, vincristine, etoposide, prednisone, and cyclophosphamide–based chemotherapy) and 21 Gy of radiation therapy from 2008 through 2016 confirmed these findings.[12]
    - At a median follow-up of 39.5 months, 3 of 54 patients (5.6%) or 3 of 108 lungs (2.8%) developed radiation pneumonitis (RP); two lungs had grade 1 RP and one lung had grade 2 RP.
    - RP was seen only in patients with a median lung dose of higher than 12.4 Gy or with an individual mean lung dose higher than 13.8 Gy.
  b. In a study of 109 patients (59% with Hodgkin lymphoma) who were irradiated at a median age of 13.8 years (range, 0.04–20.9 years; median follow-up, 3.4 years), patients were treated with a median prescribed radiation therapy dose of 21 Gy (range, 0.4–64.8 Gy); 58.7% of patients received bleomycin, and 83.5% of patients received cyclophosphamide.[13]
    - The 5-year cumulative incidence after irradiation was: pneumonitis, 6%; chronic cough, 10%; pneumonia, 35%; dyspnea, 11%; supplemental oxygen requirement, 2%; radiographic interstitial lung disease, 40%; and chest wall deformity, 12%.
    - One patient died of progressive respiratory failure.
    - Postirradiation pulmonary function tests available from 44 patients showed evidence of obstructive lung disease (25%), restrictive disease (11%), hyperinflation (32%), and abnormal diffusion capacity (12%).
    - Thoracic surgery, bleomycin, age, maximum lung irradiation dose V30 (volume of lung exposed to a radiation dose >30 Gy), and volume of lung exposed to a radiation dose of greater than 25 Gy were significant risk factors for the development of adverse pulmonary outcomes on univariate analysis.
    - Mean lung irradiation dose, maximum lung dose, and V_dose_ (percentage of volume of lung receiving the threshold dose or greater) were highly correlated. On multivariate analysis, mean lung irradiation dose was the sole significant predictor of adverse pulmonary outcome (P = .01).
2. Changes in lung function have been reported in children treated with whole-lung radiation therapy for metastatic Wilms tumor.[14,15]
  - A dose of 12 Gy to 14 Gy reduced TLC and vital capacity to about 70% of predicted values, and even lower if the patient had undergone thoracotomy.
3. Administration of bleomycin alone can produce pulmonary toxicity and, when combined with radiation therapy, can heighten radiation reactions. Chemotherapeutic agents such as doxorubicin, dactinomycin, and busulfan are radiomimetic agents and can reactivate underlying radiation damage.[14,15]

### Respiratory Complications After Chemotherapy

Chemotherapy agents with potential pulmonary toxic effects commonly used in the treatment of pediatric malignancies include bleomycin, busulfan, and the nitrosoureas (carmustine and lomustine). These agents induce lung damage on their own or potentiate the damaging effects of radiation to the lung.

Combined-modality therapy, including pulmonary toxic chemotherapy and thoracic radiation therapy or thoracic/chest wall surgery, increases the risk of pulmonary function impairment.[7]

Evidence (outcomes among cohorts treated with pulmonary toxic chemotherapy):

1. The development of bleomycin-associated pulmonary fibrosis with permanent restrictive disease is dose dependent, usually occurring at doses greater than 200 U/m^2^ to 400 U/m^2^, higher than those used in treatment protocols for pediatric malignancies.[16,17]
2. Pediatric regimens for Hodgkin lymphoma using radiation therapy and doxorubicin, bleomycin, vinblastine, and dacarbazine (ABVD) have shown a significant incidence of asymptomatic pulmonary dysfunction after treatment, which appears to improve with time.[18] However, grades 3 and 4 pulmonary toxicity was reported in 9% of children receiving 12 cycles of ABVD followed by 21 Gy of extended-field radiation.[17]
3. ABVD-related pulmonary toxic effects may result from fibrosis induced by bleomycin or radiation recall pneumonitis related to administration of doxorubicin.
4. One series included 207 children who were treated with bleomycin for Hodgkin lymphoma or germ cell tumors and had pulmonary function tests at least 1 year after the completion of therapy. At least one pulmonary function abnormality was present in 52.5% of patients. Obstructive lung disease was noted in 22.7% of patients, restrictive lung disease in 7.5%, hyperinflation in 28.8%, and nonuniform ventilation in 14%. Very few patients had pulmonary symptoms.[19]
5. Pulmonary veno-occlusive disease has been observed rarely and has been attributed to bleomycin or alkylating agents.[20,21]

### Respiratory Complications Associated With HSCT

- Patients undergoing HSCT are at increased risk of pulmonary toxic effects related to the following:[22]
  - Preexisting pulmonary dysfunction (e.g., asthma, pretransplant therapy).
  - Conditioning regimens, including cyclophosphamide, busulfan, or carmustine.
  - Total-body irradiation (TBI).
  - Graft-versus-host disease (GVHD).
- Although most survivors of transplant are not clinically compromised, restrictive lung disease may occur and has been reported to increase in prevalence with increasing time from HSCT, based on limited data from longitudinally followed cohorts.[23,24]
- Obstructive disease is less common, as is late-onset pulmonary syndrome, which includes the spectrum of restrictive and obstructive disease.
- Restrictive or interstitial lung disease has been reported in survivors of high-risk neuroblastoma who underwent an HSCT (with or without TBI). In a series of 48 survivors, radiation therapy did not have a direct correlation with pulmonary function tests, while cyclophosphamide and ifosfamide did affect pulmonary function tests. A higher median dose of cyclophosphamide was associated with restrictive lung disease, whereas higher doses of ifosfamide correlated with both restrictive lung disease and interstitial lung disease. In this cohort, 25% of the patients were symptomatic, but not all of these symptoms correlated with abnormal pulmonary function tests.[25]
- Bronchiolitis obliterans with or without organizing pneumonia, diffuse alveolar damage, and interstitial pneumonia may occur as a component of this syndrome, generally between 6 and 12 months posttransplant. Cough, dyspnea, or wheezing may occur with either normal chest x-ray or diffuse/patchy infiltrates; however, most patients are symptom free.[26,27]

### Other Factors Associated With Respiratory Late Effects

- Additional factors contributing to chronic pulmonary toxic effects include superimposed infection, underlying pneumonopathy (e.g., asthma), chest wall abnormalities, respiratory toxic effects, chronic GVHD, and the effects of chronic pulmonary involvement by tumor or reaction to tumor.[8]
- Lung lobectomy during childhood appears to have no significant impact on long-term pulmonary function,[28] but the long-term effect of lung surgery for children with cancer is not well defined.
- Pulmonary complications may also be exacerbated by smoking cigarettes or other substances. While smoking rates in survivors of childhood cancer tend to be lower than the general population, it is still important to prevent initiation of smoking and promote cessation in this distinct population.[29]

Evidence (pulmonary dysfunction in former or current smokers):

1. Pulmonary function evaluations of 433 adult survivors of childhood cancer who were treated with pulmonary toxic modalities demonstrated significantly higher risk of pulmonary dysfunction in smokers than in nonsmokers.[30]
  - FEV_1_/FVC median values among current and former smokers were lower than those who had never smoked.
  - Median FEV_1_/FVC values were lower among those who smoked less than 6 pack-years and those who smoked 6 pack-years or more compared with those who had never smoked. This suggests that survivors who are former or current smokers have an increased risk of future obstructive and restrictive lung disease.

Table 18 summarizes respiratory late effects and the related health screenings.

Table 18. Respiratory Late Effects^a^

Predisposing Therapy | Respiratory Effects | Health Screening/Interventions
Busulfan; carmustine (BCNU)/lomustine (CCNU); bleomycin; radiation exposing lungs; surgery impacting pulmonary function (lobectomy, metastasectomy, wedge resection) | Subclinical pulmonary dysfunction; interstitial pneumonitis; pulmonary fibrosis; restrictive lung disease; obstructive lung disease | History: cough, shortness of breath, dyspnea on exertion, wheezing
Busulfan; carmustine (BCNU)/lomustine (CCNU); bleomycin; radiation exposing lungs; surgery impacting pulmonary function (lobectomy, metastasectomy, wedge resection) | Subclinical pulmonary dysfunction; interstitial pneumonitis; pulmonary fibrosis; restrictive lung disease; obstructive lung disease | Pulmonary examination
Busulfan; carmustine (BCNU)/lomustine (CCNU); bleomycin; radiation exposing lungs; surgery impacting pulmonary function (lobectomy, metastasectomy, wedge resection) | Subclinical pulmonary dysfunction; interstitial pneumonitis; pulmonary fibrosis; restrictive lung disease; obstructive lung disease | Pulmonary function tests (including DLCO and spirometry)
Busulfan; carmustine (BCNU)/lomustine (CCNU); bleomycin; radiation exposing lungs; surgery impacting pulmonary function (lobectomy, metastasectomy, wedge resection) | Subclinical pulmonary dysfunction; interstitial pneumonitis; pulmonary fibrosis; restrictive lung disease; obstructive lung disease | Chest x-ray
Busulfan; carmustine (BCNU)/lomustine (CCNU); bleomycin; radiation exposing lungs; surgery impacting pulmonary function (lobectomy, metastasectomy, wedge resection) | Subclinical pulmonary dysfunction; interstitial pneumonitis; pulmonary fibrosis; restrictive lung disease; obstructive lung disease | Counsel regarding tobacco avoidance/smoking cessation
Busulfan; carmustine (BCNU)/lomustine (CCNU); bleomycin; radiation exposing lungs; surgery impacting pulmonary function (lobectomy, metastasectomy, wedge resection) | Subclinical pulmonary dysfunction; interstitial pneumonitis; pulmonary fibrosis; restrictive lung disease; obstructive lung disease | In patients with abnormal pulmonary function tests and/or chest x-ray, consider repeat evaluation before general anesthesia
Busulfan; carmustine (BCNU)/lomustine (CCNU); bleomycin; radiation exposing lungs; surgery impacting pulmonary function (lobectomy, metastasectomy, wedge resection) | Subclinical pulmonary dysfunction; interstitial pneumonitis; pulmonary fibrosis; restrictive lung disease; obstructive lung disease | Pulmonary consultation for patients with symptomatic pulmonary dysfunction
Busulfan; carmustine (BCNU)/lomustine (CCNU); bleomycin; radiation exposing lungs; surgery impacting pulmonary function (lobectomy, metastasectomy, wedge resection) | Subclinical pulmonary dysfunction; interstitial pneumonitis; pulmonary fibrosis; restrictive lung disease; obstructive lung disease | Influenza and pneumococcal vaccinations
HSCT with any history of chronic GVHD | Pulmonary toxicity (bronchiolitis obliterans, chronic bronchitis, bronchiectasis) | History: cough, shortness of breath, dyspnea on exertion, wheezing
HSCT with any history of chronic GVHD | Pulmonary toxicity (bronchiolitis obliterans, chronic bronchitis, bronchiectasis) | Pulmonary examination
HSCT with any history of chronic GVHD | Pulmonary toxicity (bronchiolitis obliterans, chronic bronchitis, bronchiectasis) | Pulmonary function tests (including DLCO and spirometry)
HSCT with any history of chronic GVHD | Pulmonary toxicity (bronchiolitis obliterans, chronic bronchitis, bronchiectasis) | Chest x-ray
HSCT with any history of chronic GVHD | Pulmonary toxicity (bronchiolitis obliterans, chronic bronchitis, bronchiectasis) | Counsel regarding tobacco avoidance/smoking cessation
HSCT with any history of chronic GVHD | Pulmonary toxicity (bronchiolitis obliterans, chronic bronchitis, bronchiectasis) | In patients with abnormal pulmonary function tests and/or chest x-ray, consider repeat evaluation before general anesthesia
HSCT with any history of chronic GVHD | Pulmonary toxicity (bronchiolitis obliterans, chronic bronchitis, bronchiectasis) | Pulmonary consultation for patients with symptomatic pulmonary dysfunction
HSCT with any history of chronic GVHD | Pulmonary toxicity (bronchiolitis obliterans, chronic bronchitis, bronchiectasis) | Influenza and pneumococcal vaccinations

DLCO = diffusing capacity of the lung for carbon monoxide; GVHD = graft-versus-host disease; HSCT = hematopoietic stem cell transplant.

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

For respiratory late effects information, including risk factors, evaluation, and health counseling, see the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### References

Smith L, Glaser AW, Peckham D, et al.: Respiratory morbidity in young people surviving cancer: Population-based study of hospital admissions, treatment-related risk factors and subsequent mortality. Int J Cancer 145 (1): 20-28, 2019.30549268
Fidler MM, Reulen RC, Bright CJ, et al.: Respiratory mortality of childhood, adolescent and young adult cancer survivors. Thorax 73 (10): 959-968, 2018.29748251
Armenian SH, Landier W, Francisco L, et al.: Long-term pulmonary function in survivors of childhood cancer. J Clin Oncol 33 (14): 1592-600, 2015.25847925
Dietz AC, Chen Y, Yasui Y, et al.: Risk and impact of pulmonary complications in survivors of childhood cancer: A report from the Childhood Cancer Survivor Study. Cancer 122 (23): 3687-3696, 2016.27504874
Green DM, Zhu L, Wang M, et al.: Pulmonary Function after Treatment for Childhood Cancer. A Report from the St. Jude Lifetime Cohort Study (SJLIFE). Ann Am Thorac Soc 13 (9): 1575-85, 2016.27391297
Huang TT, Hudson MM, Stokes DC, et al.: Pulmonary outcomes in survivors of childhood cancer: a systematic review. Chest 140 (4): 881-901, 2011.21415131
Mulder RL, Thönissen NM, van der Pal HJ, et al.: Pulmonary function impairment measured by pulmonary function tests in long-term survivors of childhood cancer. Thorax 66 (12): 1065-71, 2011.21803931
Kasteler R, Weiss A, Schindler M, et al.: Long-term pulmonary disease among Swiss childhood cancer survivors. Pediatr Blood Cancer 65 (1): , 2018.28868646
Josephson MB, Goldfarb SB: Pulmonary complications of childhood cancers. Expert Rev Respir Med 8 (5): 561-71, 2014.24865299
Briere TM, Agrusa JE, Martel MK, et al.: Acute and Late Pulmonary Effects After Radiation Therapy in Childhood Cancer Survivors: A PENTEC Comprehensive Review. Int J Radiat Oncol Biol Phys 119 (2): 533-548, 2024.35525723
Venkatramani R, Kamath S, Wong K, et al.: Pulmonary outcomes in patients with Hodgkin lymphoma treated with involved field radiation. Pediatr Blood Cancer 61 (7): 1277-81, 2014.24482138
Lewis GD, Agrusa JE, Teh BS, et al.: Radiation pneumonitis in pediatric Hodgkin lymphoma patients receiving radiation therapy to the chest. Pract Radiat Oncol 8 (5): e364-e368, 2018 Sep - Oct.29730281
Venkatramani R, Kamath S, Wong K, et al.: Correlation of clinical and dosimetric factors with adverse pulmonary outcomes in children after lung irradiation. Int J Radiat Oncol Biol Phys 86 (5): 942-8, 2013.23726005
McDonald S, Rubin P, Maasilta P: Response of normal lung to irradiation. Tolerance doses/tolerance volumes in pulmonary radiation syndromes. Front Radiat Ther Oncol 23: 255-76; discussion 299-301, 1989.2697658 90185269
McDonald S, Rubin P, Phillips TL, et al.: Injury to the lung from cancer therapy: clinical syndromes, measurable endpoints, and potential scoring systems. Int J Radiat Oncol Biol Phys 31 (5): 1187-203, 1995.7713782 95229472
Bossi G, Cerveri I, Volpini E, et al.: Long-term pulmonary sequelae after treatment of childhood Hodgkin's disease. Ann Oncol 8 (Suppl 1): 19-24, 1997.9187424 97331092
Fryer CJ, Hutchinson RJ, Krailo M, et al.: Efficacy and toxicity of 12 courses of ABVD chemotherapy followed by low-dose regional radiation in advanced Hodgkin's disease in children: a report from the Children's Cancer Study Group. J Clin Oncol 8 (12): 1971-80, 1990.1700080 91038196
Hudson MM, Greenwald C, Thompson E, et al.: Efficacy and toxicity of multiagent chemotherapy and low-dose involved-field radiotherapy in children and adolescents with Hodgkin's disease. J Clin Oncol 11 (1): 100-8, 1993.8418221
De A, Guryev I, LaRiviere A, et al.: Pulmonary function abnormalities in childhood cancer survivors treated with bleomycin. Pediatr Blood Cancer 61 (9): 1679-84, 2014.24789770
Polliack A: Late therapy-induced cardiac and pulmonary complications in cured patients with Hodgkin's disease treated with conventional combination chemo-radiotherapy. Leuk Lymphoma 15 (Suppl 1): 7-10, 1995.7767265
Ranchoux B, Günther S, Quarck R, et al.: Chemotherapy-induced pulmonary hypertension: role of alkylating agents. Am J Pathol 185 (2): 356-71, 2015.25497573
Marras TK, Chan CK, Lipton JH, et al.: Long-term pulmonary function abnormalities and survival after allogeneic marrow transplantation. Bone Marrow Transplant 33 (5): 509-17, 2004.14716347
Inaba H, Yang J, Pan J, et al.: Pulmonary dysfunction in survivors of childhood hematologic malignancies after allogeneic hematopoietic stem cell transplantation. Cancer 116 (8): 2020-30, 2010.20186702
Frisk P, Arvidson J, Hedenström H: A longitudinal study of pulmonary function after stem cell transplantation, from childhood to young adulthood. Pediatr Blood Cancer 58 (5): 775-9, 2012.21584939
Hobbie WL, Li Y, Carlson C, et al.: Late effects in survivors of high-risk neuroblastoma following stem cell transplant with and without total body irradiation. Pediatr Blood Cancer 69 (3): e29537, 2022.34971017
Uderzo C, Pillon M, Corti P, et al.: Impact of cumulative anthracycline dose, preparative regimen and chronic graft-versus-host disease on pulmonary and cardiac function in children 5 years after allogeneic hematopoietic stem cell transplantation: a prospective evaluation on behalf of the EBMT Pediatric Diseases and Late Effects Working Parties. Bone Marrow Transplant 39 (11): 667-75, 2007.17401396
Yoshihara S, Yanik G, Cooke KR, et al.: Bronchiolitis obliterans syndrome (BOS), bronchiolitis obliterans organizing pneumonia (BOOP), and other late-onset noninfectious pulmonary complications following allogeneic hematopoietic stem cell transplantation. Biol Blood Marrow Transplant 13 (7): 749-59, 2007.17580252
Kreisel D, Krupnick AS, Huddleston CB: Outcomes and late complications after pulmonary resections in the pediatric population. Semin Thorac Cardiovasc Surg 16 (3): 215-9, 2004.15619188
Gibson TM, Liu W, Armstrong GT, et al.: Longitudinal smoking patterns in survivors of childhood cancer: An update from the Childhood Cancer Survivor Study. Cancer 121 (22): 4035-43, 2015.26287647
Oancea SC, Gurney JG, Ness KK, et al.: Cigarette smoking and pulmonary function in adult survivors of childhood cancer exposed to pulmonary-toxic therapy: results from the St. Jude lifetime cohort study. Cancer Epidemiol Biomarkers Prev 23 (9): 1938-43, 2014.24939744

## Late Effects of the Special Senses

### Hearing

Hearing loss as a late effect of therapy can occur after exposure to platinum compounds (cisplatin and carboplatin), cranial radiation therapy, or both. These therapeutic exposures are most common in the treatment of central nervous system (CNS) and non-CNS solid tumors. Children are more susceptible to otologic toxic effects from platinum agents than adults.[1]

Evidence (hearing loss):

1. A longitudinal study evaluated the incidence of and risk factors for hearing loss in 171 patients (340 ears) with CNS and head and neck tumors treated with multiple ototoxic exposures. The study reported associations with severe hearing loss, ototoxic chemotherapy, and cochlea dose.[2]
  - Mean cochlea dose (odds ratio [OR], 1.04 per Gy; P < .001), time since radiation therapy (OR, 1.21 per year; P < .001), cisplatin dose (OR, 1.48 per 100 mg/m^2^; P < .001), and carboplatin dose (OR, 1.41 per 1,000 mg/m^2^; P = .002) were associated with increasing grade of hearing loss, according to the International Society of Pediatric Oncology (SIOP)-Boston ototoxicity scale.
  - The cumulative incidence of high-frequency hearing loss (>4 kHz) was 50% or greater at 5 years after radiation if mean cochlea dose was higher than 30 Gy.
  - The incidence of hearing loss across all frequencies continued to increase beyond 5 years after radiation therapy.
  - There was no synergistic effect of radiation therapy and cisplatin (interaction term, P = .53) or radiation therapy and carboplatin (interaction term, P = .85).
2. A report from the Swiss Childhood Cancer Survivor Study (CCSS) (N = 2,061) estimated the prevalence of hearing loss in survivors at 10%, compared with 3% in siblings. Hearing loss was most common in survivors of CNS tumors (25%), neuroblastomas (23%), hepatic tumors (21%), germ cell tumors (20%), bone tumors (16%), and soft tissue sarcomas (16%).[3]
  - A follow-up study from this cohort was limited to 270 childhood cancer survivors treated with platinum-based chemotherapy. Varying doses of cisplatin were used. Of those who received cisplatin, the median cumulative dose was 400 mg/m^2^ (interquartile range, 314–480 mg/m^2^). Hearing loss, assessed using audiological evaluations, was characterized as mild (20%), moderate (29%), and severe (28%). More severe hearing loss was associated with younger age at diagnosis (OR, 5.4 for <5 years), treatment in earlier years (OR, 4.8 for 1990–1995), higher cisplatin doses (OR, 13.5 for >450 mg/m^2^), concomitant cranial radiation therapy (OR, 4.4), and hematopoietic stem cell transplant (HSCT) (OR, 2.7).[4]
3. A population-based study used health registry data to evaluate the long-term incidence and predictors of hearing loss requiring hearing amplification devices (HAD) among Canadian childhood cancer survivors.[5]
  a. Among 11,842 cases and 59,210 controls identified, cases were at higher risk of needing an HAD (hazard ratio [HR], 12.8; 95% confidence interval [CI], 9.8–16.7).
  b. The cumulative incidence of HAD among survivors was 2.1% (95% CI, 1.7%–2.5%) at 20 years and increased to 6.4% (95% CI, 2.8%–12.1%) at 30 years postdiagnosis.
  c. The 30-year incidence was highest in survivors of neuroblastoma (10.7%; 95% CI, 3.8%–21.7%) and hepatoblastoma (16.2%; 95% CI, 8.6%–26.0%).
  d. In multivariable analyses, predictors of requiring an HAD included the following:
    - Age 0 to 4 years at diagnosis versus age 5 to 9 years (HR, 2.2; 95% CI, 1.4–3.3).
    - Treatment with 200 mg/m^2^ or more of cisplatin versus no cisplatin (HR, 3.1; 1.8–5.5).
    - Treatment with cranial or facial radiation therapy of higher than 32 Gy versus radiation therapy of 32 Gy or lower (HR, 2.4; 1.6–3.7).
4. Data from the North American CCSS indicated that the relative rate of first occurrence of auditory complications (i.e., problems hearing sounds, tinnitus, hearing loss, deafness) is greatest in the time period from diagnosis to 5 years postdiagnosis. However, during the period of 5 or more years postdiagnosis, the risk of developing such conditions for survivors remained significantly higher than for siblings.[6]

Risk factors associated with hearing loss include the following:

- Younger age at treatment.[5,7]
- Higher cumulative dose of platinum-based chemotherapy (≥200 mg/m^2^).[5,8] Based on the results of a multi-institutional North American cohort study (n = 1,481), significant risk factors for developing cisplatin-induced hearing loss included both the cumulative dose of cisplatin and how the cisplatin was administered. Higher fractionated doses were associated with risk of cisplatin-induced hearing loss (for each 10 mg/m^2^ increase/day: adjusted OR, 1.15; for each 50 mg/m^2^ increase per cycle: adjusted OR, 2.16).[7]
- Exposure to cisplatin combined with carboplatin.[8]
- CNS tumors.[7]
- Cranial radiation therapy.[5,7]
- Neurosurgery.

#### Hearing loss and platinum-based therapy

- Platinum-related sensorineural hearing loss develops as an acute toxicity that is generally irreversible and bilateral.[9]
- The prevalence of hearing loss has varied widely per series and is based on platinum treatment (e.g., platinum type, dose, infusion duration); host factors (e.g., age, genetic susceptibility, renal function); receipt of additional ototoxic therapy (cranial radiation therapy, aminoglycosides, loop diuretics), and the grading criteria used to report prevalence and severity of hearing loss.[8-10]
- Hearing loss manifests initially in the high frequencies and progresses to the speech frequencies with increasing cumulative exposure.[9]
- Cisplatin-induced hearing loss involving the speech frequencies (500–2,000 Hz) usually occurs with cumulative doses that exceed 400 mg/m^2^ in pediatric patients.[11,12]
- Prolonging the duration of infusion or splitting the dose has been reported to reduce the risk of significant hearing loss.[13]
- In two randomized trials (Children's Oncology Group ACCL0431 [NCT00716976] (https://www.cancer.gov/clinicaltrials/NCT00716976) and International Childhood Liver Tumour Strategy Group SIOPEL-6 [NCT00652132] (https://www.cancer.gov/clinicaltrials/NCT00652132)), sodium thiosulfate demonstrated efficacy in preventing cisplatin-induced hearing loss.[14,15]
  The SIOPEL-6 trial compared cisplatin alone with cisplatin plus delayed administration of sodium thiosulfate (sodium thiosulfate administered 6 hours after cisplatin) resulted in a 48% lower incidence of cisplatin-induced hearing loss among children with standard-risk hepatoblastoma. Sodium thiosulfate treatment did not jeopardize the overall survival or event-free survival.[15] These trials led to regulatory approval of sodium thiosulfate for prevention of cisplatin-induced hearing loss. However, each trial used a different hearing end point. In 2010, the SIOP-Boston ototoxicity scale was developed to overcome key limitations of the available scales, and it is central to harmonizing hearing end points. Using the SIOP scale, hearing outcomes from the ACCL0431 trial were re-evaluated. This analysis showed that children treated with sodium thiosulfate were approximately 90% less likely to develop higher than grade 2 cisplatin-induced hearing loss during the trial period or at the end of cisplatin therapy, compared with the observation group.[16]
- Otologic toxic effects after platinum chemotherapy have been reported to worsen years after completion of therapy.[17]
- Radiation therapy to the posterior fossa inclusive of the eighth cranial nerve (suggestive of damage to the cochlea at the end of therapy) increases the risk of late-onset hearing loss in survivors treated with cisplatin.[18]
- Carboplatin used in conventional (nonmyeloablative) dosing is typically not ototoxic.[19] However, delayed-onset hearing loss has been reported in the following populations:
  - In a cross-sectional, multicenter analysis that included 451 Dutch childhood cancer survivors who received platinum agents but not cranial radiation therapy, the incidence of ototoxicity (defined as Münster grade >2b [>20 dB at ≥4–8kHz]) associated with the use of carboplatin alone (n = 112) was 17%.[8]
  - A single study of otologic toxic effects after non-HSCT dosing of carboplatin for retinoblastoma reported that 8 of 175 children developed hearing loss. For seven of the eight children, the onset of the otologic toxic effects was delayed a median of 3.7 years.[20]
  - Another study that evaluated audiological outcomes among 60 retinoblastoma survivors treated with nonmyeloablative systemic carboplatin and vincristine estimated a cumulative incidence of hearing loss of 20.3% at 10 years.[21]
    - Among the ten patients (17%) who developed sustained grade 3 or grade 4 hearing loss, nine were younger than 6 months at the start of chemotherapy.
    - Younger age at the start of treatment was the only significant predictor of hearing loss. The cumulative incidence of hearing loss was 39% for patients younger than 6 months versus only 8.3% for patients aged 6 months and older.
- The use of a carboplatin conditioning regimen for HSCT, particularly in combination with previous carboplatin or cisplatin therapy, may cause significant otologic toxic effects.[11,12]
  - One series evaluated 115 patients with recurrent or refractory germ cell tumors (median age, 32 years) who had received first-line cisplatin-based chemotherapy. The study reported hearing outcomes for adolescents and young adults treated with three cycles of high-dose carboplatin therapy. Of the 106 patients with normal hearing or mild hearing loss before high-dose carboplatin therapy, 70 (66%) developed moderate-to-profound hearing loss in the speech frequencies after high-dose carboplatin therapy. Twenty-five patients (22%) were recommended for hearing aids after high-dose carboplatin therapy. Patients with moderate-to-profound hearing loss isolated to higher frequencies before high-dose carboplatin therapy were more likely to develop moderate-to-profound hearing loss in the speech frequencies after therapy and be recommended for hearing aids.[22]

#### Hearing loss and cranial radiation therapy

- Cranial radiation therapy, when used as a single modality, may result in otologic toxic effects that may be gradual in onset, manifesting months to years after exposure. The threshold dose for auditory toxicity after radiation therapy alone is in the range of 35 Gy to 45 Gy for children.[23]
- High-frequency sensorineural hearing loss is uncommon at cumulative radiation doses below 35 Gy, and is rarely severe below doses of 45 Gy.[24] The exception is for patients with supratentorial tumors and ventriculoperitoneal shunts, in whom doses below 30 Gy may be associated with intermediate frequency (1,000–2,000 Hz) hearing loss.[23,25]
- To reduce the risk of hearing loss, the average cochlear dose should not exceed 30 Gy to 35 Gy, delivered over 6 weeks.
- Sensorineural hearing loss after cranial radiation therapy can progress over time.
  - A study included 235 pediatric patients with brain tumors who were treated with conformal or intensity-modulated radiation therapy (without cisplatin or preexisting hearing loss) and monitored for a median of 9 years. Sensorineural hearing loss was prevalent in 14% of patients, with a median time to onset of 3.6 years from radiation therapy.[26]
    - Follow-up evaluations among 29 patients identified continued decline in hearing sensitivity.
    - Risk factors for cranial radiation–associated sensorineural hearing loss included younger age at initiation of radiation, higher cochlear radiation dose, and cerebrospinal fluid shunting.
- When used concomitantly with cisplatin, radiation therapy can substantially exacerbate the hearing loss associated with platinum chemotherapy.[23,27-29]
- In two reports from the CCSS, the following clinical and genetic factors were reported in 5-year cancer survivors:
  - Increased risk of problems with hearing sounds (relative risk [RR], 2.3), tinnitus (RR, 1.7), hearing loss requiring an aid (RR, 4.4), and hearing loss in one or both ears not corrected by a hearing aid (RR, 5.2), compared with siblings. Temporal lobe irradiation (>30 Gy) and posterior fossa irradiation (>50 Gy but also 30–49.9 Gy) were associated with these adverse outcomes.[6]
  - Exposure to platinum was associated with an increased risk of problems with hearing sounds (RR, 2.1), tinnitus (RR, 2.8), and hearing loss requiring an aid (RR, 4.1).[6]
  - Males were more likely than females to report cranial radiation therapy–related tinnitus (9.4% vs. 5.4%) and hearing loss (14.0% vs. 10.7%).[30]
  - Survivors with tinnitus or hearing loss were more likely than controls to experience persistent dizziness or vertigo, take antidepressants, and report poorer overall health.[30]
  - A genome-wide association study identified a single-nucleotide polymorphism on chromosome 6 as nearly genome-wide significant for association with cranial radiation therapy–related hearing loss. A replication analysis in the St. Jude Life (SJLIFE) cohort study supported its significant association with cranial radiation therapy–related and de novo hearing loss.[30]
- The Pediatric Normal Tissue Effects in the Clinic (PENTEC) investigation included 457 cochleas at risk in patients treated with radiation therapy without chemotherapy, and 398 cochleas in patients treated with chemotherapy.[31]
  - The incidence and severity of cochlear hearing loss from radiation therapy exposure alone is related to dose and age. Risk of hearing loss was less than 5% in cochlea receiving a mean dose 35 Gy or lower but increased to 30% at a dose of 50 Gy.
  - Hearing loss risk ranged from 25% to 40% in children younger than 5 years at diagnosis, declining to 10% in older children for any radiation dose.
  - Probability of similar severe hearing loss occurred at doses 18.3 Gy higher for children younger than 3 years than those older than 3 years.
  - High-frequency hearing loss was most common, with average onset occurring 3.6 years (range, 0.4–13.2 years) after radiation therapy.
  - Low-frequency hearing loss was also seen after radiation therapy (in contrast with chemotherapy that primarily affects high frequency).
- Chronic comorbidities were assessed in a cohort of 6,778 2-year survivors of adolescent and young adult cancer (defined as diagnosed with cancer between the ages of 15–39 years), with a median follow-up of 5.1 years after cancer diagnosis. The risk of developing chronic comorbidities was compared with matched individuals without a history of cancer. The crude incidence rate ratio (IRR) was 3.0 for hearing loss associated with radiation exposure higher than 30 Gy to the head. In multivariate analyses, a combined exposure to platinum (>450 mg/m^2^) and radiation to the head (30 Gy) was associated with increased risk of hearing loss (IRR,14.9).[32]

#### Hearing loss and quality of life

Children treated for malignancies may be at risk of early- or delayed-onset hearing loss. This can affect learning, communication, school performance, social interaction, and overall quality of life.

- Hearing sensitivity is measured by pure-tone audiometry. This assessment does not measure the social and emotional impact of hearing loss. The functional impact of treatment-induced hearing loss on quality of life was examined in adult survivors of childhood cancer from the SJLIFE cohort study. These survivors had been treated with platinum chemotherapy or head/neck radiation therapy and had documented hearing loss (n = 237).[33] Participants were assessed using the Hearing Handicap Inventory for Adults. Survivors with severe hearing loss (n = 156) had increased likelihood of social isolation (OR, 8.76), depression (OR, 9.11), anxiety (OR, 17.57), reduced personal income (OR, 2.82), and less full-time employment (OR, 2.47). Survivors who did not use a recommended hearing aid were twice as likely to have less than full-time employment (OR, 2.26) and reduced personal income (OR, 2.24) than survivors who wore a hearing aid.
- Among 137 childhood survivors of neuroblastoma (aged 8–17 years), hearing loss was associated with reading and math skill problems, as well as higher risk of learning disability and/or special education needs. In addition, hearing loss was associated with poorer school-related quality of life.[34]
- Serial neurocognitive and audiology evaluations were performed on 260 children and young adults with embryonal brain tumors who were enrolled on a treatment protocol that consisted of surgery, risk-adapted cranial spinal irradiation, and chemotherapy. The 64 children with severe sensorineural hearing loss exhibited greater reading difficulties over time compared with the group of children with normal or mild-to-moderate sensorineural hearing loss. Specifically, these children with severe sensorineural hearing loss seemed to struggle most with phonological skills and processing speed, which affect higher level skills such as reading comprehension.[35]
- In a study of adult survivors of pediatric CNS tumors (n = 180) and non-CNS solid tumors (n = 226) who were treated with potentially ototoxic cancer therapy, serious hearing loss (requiring aid or resulting in deafness) was associated with a twofold increased risk of dependent living and unemployment or not graduating from high school.[36]

The Children’s Oncology Group has published recommendations for the evaluation and management of hearing loss in survivors of childhood and adolescent cancers to promote early identification of at-risk survivors and timely referral for remedial services.

Table 19 summarizes auditory late effects and the related health screenings.

Table 19. Auditory Late Effects^a^

Predisposing Therapy | Potential Auditory Effects | Health Screening/Interventions
Platinum agents (cisplatin, carboplatin); radiation exposing the ear | Otologic toxic effects; sensorineural hearing loss; tinnitus; vertigo; dehydrated ceruminosis; conductive hearing loss | History: hearing difficulties, tinnitus, vertigo
Platinum agents (cisplatin, carboplatin); radiation exposing the ear | Otologic toxic effects; sensorineural hearing loss; tinnitus; vertigo; dehydrated ceruminosis; conductive hearing loss | Otoscopic examination
Platinum agents (cisplatin, carboplatin); radiation exposing the ear | Otologic toxic effects; sensorineural hearing loss; tinnitus; vertigo; dehydrated ceruminosis; conductive hearing loss | Audiology evaluation
Platinum agents (cisplatin, carboplatin); radiation exposing the ear | Otologic toxic effects; sensorineural hearing loss; tinnitus; vertigo; dehydrated ceruminosis; conductive hearing loss | Amplification in patients with progressive hearing loss
Platinum agents (cisplatin, carboplatin); radiation exposing the ear | Otologic toxic effects; sensorineural hearing loss; tinnitus; vertigo; dehydrated ceruminosis; conductive hearing loss | Speech and language therapy for children with hearing loss
Platinum agents (cisplatin, carboplatin); radiation exposing the ear | Otologic toxic effects; sensorineural hearing loss; tinnitus; vertigo; dehydrated ceruminosis; conductive hearing loss | Otolaryngology consultation in patients with chronic infection, cerumen impaction, or other anatomical problems exacerbating or contributing to hearing loss
Platinum agents (cisplatin, carboplatin); radiation exposing the ear | Otologic toxic effects; sensorineural hearing loss; tinnitus; vertigo; dehydrated ceruminosis; conductive hearing loss | Educational accommodations (e.g., preferential classroom seating, FM amplification system, etc.)

FM = frequency modulated.

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### Orbital and Optic

Orbital complications are common after radiation therapy for retinoblastoma, head and neck sarcomas, CNS tumors, and after total-body irradiation (TBI).

#### Retinoblastoma

- Progress has been made in the management of retinoblastoma, with better enucleation implants, intravenous chemoreduction, and intra-arterial chemotherapy in addition to intravitreal chemotherapy, thermotherapy, cryotherapy, and plaque radiation therapy.[37,38] Longer follow-up is needed to assess the impact on vision in patients undergoing these more contemporary treatment modalities.
- Previously, tumors located near the macula and fovea were associated with an increased risk of complications leading to vision loss, although treatment of these tumors with foveal laser ablation has shown promise in preserving vision.[39,40]
- In a study of 61 patients (94 eyes) with a mean follow-up of 51.8 months, a mean lens dose of 7 Gy was associated with a 5-year incidence of cataracts of 20% to 25%.[41]
- In a study of 64 eyes from 42 patients (22 bilateral cases) with salvaged retinoblastoma, after a mean follow-up of 8 years, strabismus was found to be a very common adverse sequela, with 69% of patients having some type of deviation. Exotropia (43%) was more common. Foveal tumor at presentation was found to be the only significant risk factor.[42]
- For survivors of retinoblastoma, a small orbital volume may result from either enucleation or radiation therapy.
- Age younger than 1 year may increase the risk of orbital complications, but this finding is not consistent across studies.[43,44]
- A qualitative analysis of survey responses from 404 survivors of retinoblastoma (mean time since diagnosis, 42 years) who had undergone enucleation identified psychosocial effects related to physical and intrapersonal struggles with appearance and social and relational problems, particularly with teasing and bullying.[45]

The PENTEC ocular task force reviewed dosimetric and clinical factors to quantify the radiation dose dependence of late ocular adverse effects, including retinopathy, optic neuropathy, and cataract, in childhood cancer survivors who received cranial radiation therapy.[46]

- Based on limited data, the model for development of retinopathy suggests a 5% and 50% risk of toxicity at 42 Gy and 62 Gy, respectively.
- The model for development of optic neuropathy suggests a 5% and 50% risk of toxicity at 57 Gy and 64 Gy, respectively.
- The models for cataracts suggest a 5% and 50% risk of self-reported cataract at 12 Gy and higher than 40 Gy, respectively, and a 50% risk of ophthalmologist-diagnosed cataract at 9 Gy (>5% long-term risk at 0 Gy in patients treated with chemotherapy only).

For more information about the treatment of retinoblastoma, see Retinoblastoma Treatment.

#### Rhabdomyosarcoma

- Survivors of orbital rhabdomyosarcoma are at risk of dry eye, cataract, orbital hypoplasia, ptosis, retinopathy, keratoconjunctivitis, optic neuropathy, lid epithelioma, and impairment of vision after radiation therapy doses of 30 Gy to 65 Gy.[47,48] Despite dosimetric precision of proton therapy, orbital asymmetry is reported to develop after higher than 40 Gy relative biological effectiveness (RBE) to multiple bones of the orbital rim.[49]
- Over the past 3 decades, radiation therapy treatment techniques have evolved. These techniques were examined in a multinational, trans-Atlantic study of head and neck rhabdomyosarcoma survivors in which facial deformity likely occurred as a result of local control. Based on tumor site, there was reduced facial growth in survivors with nonparameningeal primary tumors (P = .002), and parameningeal primary tumors (P < .001), but not for orbital primary tumors (P = .080), when compared with healthy controls. In the four different local therapy strategies used (proton therapy, photon therapy, surgery with radiation therapy, and surgery with brachytherapy), local control and survival were comparable. When comparing radiation therapy with surgery and brachytherapy, orbital patients had more facial deformations.[50]
- The higher radiation therapy dose ranges (>50 Gy) are associated with lid epitheliomas, keratoconjunctivitis, lacrimal duct atrophy, and severe dry eye.
- Retinitis and optic neuropathy may also result from doses of 50 Gy to 65 Gy and even at lower total doses if the individual fraction size is higher than 2 Gy.[51]
- Cataracts are reported after lower doses of 10 Gy to 18 Gy.[47]

For more information about the treatment of rhabdomyosarcoma in children, see Childhood Rhabdomyosarcoma Treatment.

#### Low-grade optic pathway glioma

Survivors of optic pathway gliomas are also at risk of visual complications, resulting in part from tumor proximity to the optic nerve.

- In a retrospective cohort study of 59 pediatric patients with sporadic optic pathway gliomas diagnosed between 1990 and 2014 (median follow-up, 5.2 years), there was a significant burden of long-term visual impairment.[52]
  - More than two-thirds of the patients had evidence of long-term vision loss, more than one-half had severe vision loss in at least one eye, and one-quarter of the patients had severe bilateral vision loss.
  - Identified risk factors for poor visual outcome were postchiasmal involvement, younger age, and optic nerve pallor at presentation.
- Longitudinal follow-up (mean, 9 years) of 21 patients with optic pathway gliomas indicated that before treatment, 81% of patients had reduced visual acuity, 81% had optic nerve pallor, and all had reduced visual evoked potentials in one or both eyes.[53]
  - Treatment arrested acuity loss for 4 to 5 years.
  - Visual acuity was stable or improved in 33% of patients at last follow-up; however, it declined on average. Visual acuity at follow-up was related to tumor volume at initial presentation.
- In a study of 51 children with low-grade gliomas and low-grade glioneural tumors diagnosed within the first year of life, visual acuity was decreased in 27 of 48 patients (56%), 13 (27%) of whom were legally blind. The tumor location (hypothalamic or optic pathway) was significantly associated with decreased visual acuity (P = .002).[54]
- CCSS investigators evaluated the impact of impaired vision on cognitive and psychosocial outcomes among 1,233 adult survivors of childhood low-grade gliomas.[55]
  - Some degree of visual impairment was prevalent in 22.5% of patients, and 3.8% of patients were blind in both eyes.
  - Survivors who were blind in both eyes were more likely to be unmarried, live dependently, and be unemployed than were survivors with unimpaired vision.
  - Bilateral blindness did not impact self-reported cognitive or emotional outcomes. Impaired (with some remaining) vision was not associated with psychological or economic outcomes.

#### Treatment-specific effects

Survivors of childhood cancer are at increased risk of ocular late effects related to both glucocorticoid and radiation exposure to the eye.

Evidence (cataract development from radiation exposure):

1. The CCSS reported the increased risk of developing vision late effects in survivors who were 5 or more years from diagnosis. These late effects included cataracts (RR, 10.8), glaucoma (RR, 2.5), legal blindness (RR, 2.6), double vision (RR, 4.1), and dry eye (RR, 1.9), compared with siblings.[56] In a separate report, the authors provided additional data on the interval from radiation therapy and the radiation dose associated with cataract development.[57] Among 13,902 study participants, 3.5% developed cataracts (41% within 5 years of radiation therapy), with a median time to onset of 9.6 years and a maximum time of 37 years. Lens radiation doses were associated with an increased prevalence: 1.3% if less than 0.5 Gy, 6.1% after 2.5 to 3.49 Gy, and 40.6% after 20 to 60 Gy.
  - Higher doses were associated with a shorter time interval to diagnosis. Of the group with cataracts, 31% reported having cataract surgery, supporting the clinical consequences.
  - Cytosine arabinoside (OR, 1.5) and doxorubicin (OR, 1.5) were independently associated with cataract development, methotrexate was inversely associated (OR, 0.6), and no positive interaction between the use of corticosteroids and radiation therapy was observed.
2. In a cohort of 517 survivors of childhood acute lymphoblastic leukemia (median time from diagnosis, 10.9 years) who were all evaluated by slit lamp examination, the 15-year cumulative incidence of cataract was 4.5%. CNS radiation therapy was the only treatment-related risk factor identified for cataract development, which occurred in 11.1% of irradiated survivors, compared with 2.8% of those who were not irradiated.[58]

Visual acuity decline is rare after radiation therapy for intracranial malignancies in children.

Evidence (visual acuity decline from radiation exposure):

1. A retrospective study of 458 children (875 at-risk eyes) treated with proton therapy for intracranial malignancy assessed radiation therapy–related visual decline. Eyes were considered at risk if either the ipsilateral optic nerve or optic chiasm received 30 GyRBE or higher to 0.1 cm^3^.[59]
  - No patients experienced complete vision loss.
  - The actuarial 5-year rate of visual acuity decline was 2.6%.
  - Tumor location significantly correlated with risk. Investigators found that children with tumors of the suprasellar or the optic pathway region are at greatest risk. The reported risk was about 5% decline in visual acuity with a dose of 56 GyRBE to the optic nerve or optic pathway.
  - For children with tumors arising elsewhere in the brain, no toxicity was observed.

Chronic comorbidities were assessed in a cohort of 6,778 2-year survivors of adolescent and young adult cancer (defined as diagnosed with cancer between the ages of 15–39 years), with a median follow-up of 5.1 years after cancer diagnosis. The risk of developing chronic comorbidities was compared with matched individuals without a history of cancer. The crude IRR was 8.1 for vision loss associated with radiation exposure higher than 30 Gy to the head.[32]

Ocular complications, such as cataracts and dry eye syndrome, are common after HSCT in childhood.

Evidence (ocular effects of HSCT):

1. A St. Jude Children's Research Hospital investigation evaluated ocular complications in school-aged children and adolescents who survived at least 1 year following allogeneic HSCT. Among 162 patients (mean age at transplant, 13.4 years; mean follow-up, 4 years), the following was reported:[60]
  - Cataract formation was noted in 57 patients (35%) and dry eye was noted in 51 patients (31%).
  - Multivariate analysis of significant variables showed that TBI was a risk factor for cataract formation, and chronic graft-versus-host disease (GVHD) was a significant risk factor for dry eye syndrome.
2. Compared with patients treated with busulfan or other chemotherapy, patients treated with single-dose or fractionated TBI are at increased risk of cataracts.[61-64]
  - The risk ranges from approximately 10% to 60% at 10 years posttreatment, depending on the total dose and fractionation, with a shorter latency period and more severe cataracts noted after single fraction and higher dose or dose-rate TBI.
3. One series evaluated 48 patients with high-risk neuroblastoma (median years since diagnosis, 14.1 years) who were all treated with multimodal therapy, including high-dose chemotherapy, HSCT (with or without TBI), radiation therapy, and immunotherapy.[10]
  - Twenty-five of the survivors (52%) developed cataracts.
  - All patients with cataracts had received TBI (P < .0001).
4. Patients receiving TBI doses of less than 40 Gy have a less than 10% chance of developing severe cataracts.[64]
5. Corticosteroids and GVHD may further increase risk.[61,65]
6. The prevalence of cataracts, evaluated by serial slit lamp testing, among 271 participants (mean follow-up, 10.3 years) in the Leucémie de l'Enfant et de l'Adolescent (LEA) program was 41.7%, with 8.1% requiring surgical intervention.[66]
  - The cumulative incidence of cataracts among those treated with TBI increased over time from 30% at 5 years to 70.8% at 15 years and 78% at 20 years.
  - The lack of a plateau in cataract incidence suggests that nearly all patients treated with TBI will develop cataracts as follow-up increases.
  - In contrast, the 15-year cumulative incidence of cataracts was 12.5% among those conditioned with busulfan.
  - Multivariable analysis identified high cumulative steroid dose as a potential cofactor with TBI for cataract risk.
7. Dry eye syndrome is the most common manifestation of chronic ocular GVHD, but it may occur as an isolated phenomenon in the absence of GVHD.
  1. A single-center study evaluated 484 consecutive children receiving HSCT who had ophthalmological examinations performed before HSCT and then annually until 5 years after HSCT.[67]
    - The cumulate incidence of chronic ocular GVHD was 6.0%.
    - The cumulative incidence of new-onset dry eye disease was 8.7%.
    - Younger age (0–4 years vs. age 10–16 years) was associated with reduced risk of dry eye disease.

Table 20 summarizes ocular late effects and the related health screenings.

Table 20. Ocular Late Effects^a^

Predisposing Therapy | Ocular/Vision Effects | Health Screening/Interventions
Busulfan; corticosteroids; radiation exposing the eye | Cataracts | History: decreased acuity, halos, diplopia
Busulfan; corticosteroids; radiation exposing the eye | Cataracts | Eye examination: visual acuity, funduscopy (yearly)
Busulfan; corticosteroids; radiation exposing the eye | Cataracts | Ophthalmology consultation
Radiation exposing the eye, including radioiodine (131I) | Ocular toxicity (orbital hypoplasia, lacrimal duct atrophy, xerophthalmia [keratoconjunctivitis sicca], keratitis, telangiectasias, retinopathy, optic chiasm neuropathy, enophthalmos, chronic painful eye, maculopathy, papillopathy, glaucoma) | History: visual changes (decreased acuity, halos, diplopia), dry eye, persistent eye irritation, excessive tearing, light sensitivity, poor night vision, painful eye
Radiation exposing the eye, including radioiodine (131I) | | Eye examination: visual acuity, funduscopy (yearly)
Radiation exposing the eye, including radioiodine (131I) | | Ophthalmology consultation
HSCT with any history of chronic GVHD | Xerophthalmia (keratoconjunctivitis sicca) | History: dry eye (burning, itching, foreign body sensation, inflammation)
HSCT with any history of chronic GVHD | Xerophthalmia (keratoconjunctivitis sicca) | Eye examination: visual acuity, funduscopy (yearly)
Enucleation | Impaired cosmesis; poor prosthetic fit; orbital hypoplasia | Ocular prosthetic evaluation
Enucleation | Impaired cosmesis; poor prosthetic fit; orbital hypoplasia | Ophthalmology

GVHD = graft-versus-host disease; HSCT = hematopoietic stem cell transplant; 131I = iodine I 131.

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

For information on the late effects of special senses, including risk factors, evaluation, and health counseling, see the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### References

Li Y, Womer RB, Silber JH: Predicting cisplatin ototoxicity in children: the influence of age and the cumulative dose. Eur J Cancer 40 (16): 2445-51, 2004.15519518
Keilty D, Khandwala M, Liu ZA, et al.: Hearing Loss After Radiation and Chemotherapy for CNS and Head-and-Neck Tumors in Children. J Clin Oncol 39 (34): 3813-3821, 2021.34570616
Weiss A, Sommer G, Kasteler R, et al.: Long-term auditory complications after childhood cancer: A report from the Swiss Childhood Cancer Survivor Study. Pediatr Blood Cancer 64 (2): 364-373, 2017.27650356
Strebel S, Mader L, Sláma T, et al.: Severity of hearing loss after platinum chemotherapy in childhood cancer survivors. Pediatr Blood Cancer 69 (9): e29755, 2022.35723448
Beyea JA, Lau C, Cooke B, et al.: Long-Term Incidence and Predictors of Significant Hearing Loss Requiring Hearing Assistive Devices Among Childhood Cancer Survivors: A Population-Based Study. J Clin Oncol 38 (23): 2639-2646, 2020.32463737
Whelan K, Stratton K, Kawashima T, et al.: Auditory complications in childhood cancer survivors: a report from the childhood cancer survivor study. Pediatr Blood Cancer 57 (1): 126-34, 2011.21328523
Moke DJ, Luo C, Millstein J, et al.: Prevalence and risk factors for cisplatin-induced hearing loss in children, adolescents, and young adults: a multi-institutional North American cohort study. Lancet Child Adolesc Health 5 (4): 274-283, 2021.33581749
Clemens E, de Vries AC, Pluijm SF, et al.: Determinants of ototoxicity in 451 platinum-treated Dutch survivors of childhood cancer: A DCOG late-effects study. Eur J Cancer 69: 77-85, 2016.27821322
Brock PR, Knight KR, Freyer DR, et al.: Platinum-induced ototoxicity in children: a consensus review on mechanisms, predisposition, and protection, including a new International Society of Pediatric Oncology Boston ototoxicity scale. J Clin Oncol 30 (19): 2408-17, 2012.22547603
Hobbie WL, Li Y, Carlson C, et al.: Late effects in survivors of high-risk neuroblastoma following stem cell transplant with and without total body irradiation. Pediatr Blood Cancer 69 (3): e29537, 2022.34971017
Kushner BH, Budnick A, Kramer K, et al.: Ototoxicity from high-dose use of platinum compounds in patients with neuroblastoma. Cancer 107 (2): 417-22, 2006.16779793
Landier W, Knight K, Wong FL, et al.: Ototoxicity in children with high-risk neuroblastoma: prevalence, risk factors, and concordance of grading scales--a report from the Children's Oncology Group. J Clin Oncol 32 (6): 527-34, 2014.24419114
Lewis MJ, DuBois SG, Fligor B, et al.: Ototoxicity in children treated for osteosarcoma. Pediatr Blood Cancer 52 (3): 387-91, 2009.19061216
Freyer DR, Chen L, Krailo MD, et al.: Effects of sodium thiosulfate versus observation on development of cisplatin-induced hearing loss in children with cancer (ACCL0431): a multicentre, randomised, controlled, open-label, phase 3 trial. Lancet Oncol 18 (1): 63-74, 2017.27914822
Brock PR, Maibach R, Childs M, et al.: Sodium Thiosulfate for Protection from Cisplatin-Induced Hearing Loss. N Engl J Med 378 (25): 2376-2385, 2018.29924955
Orgel E, Knight KR, Villaluna D, et al.: Reevaluation of sodium thiosulfate otoprotection using the consensus International Society of Paediatric Oncology Ototoxicity Scale: A report from the Children's Oncology Group study ACCL0431. Pediatr Blood Cancer : e30550, 2023.37416942
Clemens E, de Vries AC, Am Zehnhoff-Dinnesen A, et al.: Hearing loss after platinum treatment is irreversible in noncranial irradiated childhood cancer survivors. Pediatr Hematol Oncol 34 (2): 120-129, 2017.28590156
Kolinsky DC, Hayashi SS, Karzon R, et al.: Late onset hearing loss: a significant complication of cancer survivors treated with Cisplatin containing chemotherapy regimens. J Pediatr Hematol Oncol 32 (2): 119-23, 2010.20098336
Fouladi M, Gururangan S, Moghrabi A, et al.: Carboplatin-based primary chemotherapy for infants and young children with CNS tumors. Cancer 115 (14): 3243-53, 2009.19484793
Jehanne M, Lumbroso-Le Rouic L, Savignoni A, et al.: Analysis of ototoxicity in young children receiving carboplatin in the context of conservative management of unilateral or bilateral retinoblastoma. Pediatr Blood Cancer 52 (5): 637-43, 2009.19148943
Qaddoumi I, Bass JK, Wu J, et al.: Carboplatin-associated ototoxicity in children with retinoblastoma. J Clin Oncol 30 (10): 1034-41, 2012.22370329
Funt SA, Knezevic A, Wilson K, et al.: Ototoxicity associated with high-dose carboplatin for patients with previously treated germ cell tumors. Cancer 129 (24): 3952-3961, 2023.37715631
Hua C, Bass JK, Khan R, et al.: Hearing loss after radiotherapy for pediatric brain tumors: effect of cochlear dose. Int J Radiat Oncol Biol Phys 72 (3): 892-9, 2008.18395355
Bhandare N, Jackson A, Eisbruch A, et al.: Radiation therapy and hearing loss. Int J Radiat Oncol Biol Phys 76 (3 Suppl): S50-7, 2010.20171518
Merchant TE, Gould CJ, Xiong X, et al.: Early neuro-otologic effects of three-dimensional irradiation in children with primary brain tumors. Int J Radiat Oncol Biol Phys 58 (4): 1194-207, 2004.15001264
Bass JK, Hua CH, Huang J, et al.: Hearing Loss in Patients Who Received Cranial Radiation Therapy for Childhood Cancer. J Clin Oncol 34 (11): 1248-55, 2016.26811531
Cheuk DK, Billups CA, Martin MG, et al.: Prognostic factors and long-term outcomes of childhood nasopharyngeal carcinoma. Cancer 117 (1): 197-206, 2011.20737561
Merchant TE, Hua CH, Shukla H, et al.: Proton versus photon radiotherapy for common pediatric brain tumors: comparison of models of dose characteristics and their relationship to cognitive function. Pediatr Blood Cancer 51 (1): 110-7, 2008.18306274
Paulino AC, Lobo M, Teh BS, et al.: Ototoxicity after intensity-modulated radiation therapy and cisplatin-based chemotherapy in children with medulloblastoma. Int J Radiat Oncol Biol Phys 78 (5): 1445-50, 2010.20231075
Trendowski MR, Baedke JL, Sapkota Y, et al.: Clinical and genetic risk factors for radiation-associated ototoxicity: A report from the Childhood Cancer Survivor Study and the St. Jude Lifetime Cohort. Cancer 127 (21): 4091-4102, 2021.34286861
Murphy B, Jackson A, Bass JK, et al.: Modeling the Risk of Hearing Loss From Radiation Therapy in Childhood Cancer Survivors: A PENTEC Comprehensive Review. Int J Radiat Oncol Biol Phys 119 (2): 446-456, 2024.37855793
Chao C, Bhatia S, Xu L, et al.: Chronic Comorbidities Among Survivors of Adolescent and Young Adult Cancer. J Clin Oncol 38 (27): 3161-3174, 2020.32673152
Bass JK, Wang F, Thaxton ME, et al.: Association of hearing loss with patient-reported functional outcomes in adult survivors of childhood cancer. J Natl Cancer Inst 116 (4): 596-605, 2024.38048603
Gurney JG, Tersak JM, Ness KK, et al.: Hearing loss, quality of life, and academic problems in long-term neuroblastoma survivors: a report from the Children's Oncology Group. Pediatrics 120 (5): e1229-36, 2007.17974716
Olivier TW, Bass JK, Ashford JM, et al.: Cognitive Implications of Ototoxicity in Pediatric Patients With Embryonal Brain Tumors. J Clin Oncol 37 (18): 1566-1575, 2019.31046551
Brinkman TM, Bass JK, Li Z, et al.: Treatment-induced hearing loss and adult social outcomes in survivors of childhood CNS and non-CNS solid tumors: Results from the St. Jude Lifetime Cohort Study. Cancer 121 (22): 4053-61, 2015.26287566
Shields CL, Bas Z, Tadepalli S, et al.: Long-term (20-year) real-world outcomes of intravenous chemotherapy (chemoreduction) for retinoblastoma in 964 eyes of 554 patients at a single centre. Br J Ophthalmol 104 (11): 1548-1555, 2020.32051141
Francis JH, Brodie SE, Marr B, et al.: Efficacy and Toxicity of Intravitreous Chemotherapy for Retinoblastoma: Four-Year Experience. Ophthalmology 124 (4): 488-495, 2017.28089679
Shields CL, Shields JA, Cater J, et al.: Plaque radiotherapy for retinoblastoma: long-term tumor control and treatment complications in 208 tumors. Ophthalmology 108 (11): 2116-21, 2001.11713089 21570621
Schefler AC, Cicciarelli N, Feuer W, et al.: Macular retinoblastoma: evaluation of tumor control, local complications, and visual outcomes for eyes treated with chemotherapy and repetitive foveal laser ablation. Ophthalmology 114 (1): 162-9, 2007.17070578
Nguyen SM, Sison J, Jones M, et al.: Lens Dose-Response Prediction Modeling and Cataract Incidence in Patients With Retinoblastoma After Lens-Sparing or Whole-Eye Radiation Therapy. Int J Radiat Oncol Biol Phys 103 (5): 1143-1150, 2019.30537543
Fabian ID, Stacey AW, Naeem Z, et al.: Strabismus in retinoblastoma survivors with long-term follow-up. J AAPOS 22 (4): 276.e1-276.e7, 2018.30009948
Kaste SC, Chen G, Fontanesi J, et al.: Orbital development in long-term survivors of retinoblastoma. J Clin Oncol 15 (3): 1183-9, 1997.9060562 97213873
Peylan-Ramu N, Bin-Nun A, Skleir-Levy M, et al.: Orbital growth retardation in retinoblastoma survivors: work in progress. Med Pediatr Oncol 37 (5): 465-70, 2001.11745876 21612258
Banerjee SC, Pottenger E, Petriccione M, et al.: Impact of enucleation on adult retinoblastoma survivors' quality of life: A qualitative study of survivors' perspectives. Palliat Support Care 18 (3): 322-331, 2020.31699178
Shen CJ, Kry SF, Buchsbaum JC, et al.: Retinopathy, Optic Neuropathy, and Cataract in Childhood Cancer Survivors Treated With Radiation Therapy: A PENTEC Comprehensive Review. Int J Radiat Oncol Biol Phys 119 (2): 431-445, 2024.37565958
Raney RB, Anderson JR, Kollath J, et al.: Late effects of therapy in 94 patients with localized rhabdomyosarcoma of the orbit: Report from the Intergroup Rhabdomyosarcoma Study (IRS)-III, 1984-1991. Med Pediatr Oncol 34 (6): 413-20, 2000.10842248 20302971
Paulino AC, Simon JH, Zhen W, et al.: Long-term effects in children treated with radiotherapy for head and neck rhabdomyosarcoma. Int J Radiat Oncol Biol Phys 48 (5): 1489-95, 2000.11121653 20573313
Hol MLF, Indelicato DJ, Rotondo RL, et al.: Dose-Effect Analysis of Early Changes in Orbital Bone Morphology After Radiation Therapy for Rhabdomyosarcoma. Pract Radiat Oncol 10 (1): 53-58, 2020.31629089
Hol MLF, Indelicato DJ, Slater O, et al.: Facial deformation following treatment for pediatric head and neck rhabdomyosarcoma; the difference between treatment modalities. Results of a trans-Atlantic, multicenter cross-sectional cohort study. Pediatr Blood Cancer 70 (8): e30412, 2023.37249325
Kline LB, Kim JY, Ceballos R: Radiation optic neuropathy. Ophthalmology 92 (8): 1118-26, 1985.4047605 86015482
Wan MJ, Ullrich NJ, Manley PE, et al.: Long-term visual outcomes of optic pathway gliomas in pediatric patients without neurofibromatosis type 1. J Neurooncol 129 (1): 173-8, 2016.27311725
Kelly JP, Leary S, Khanna P, et al.: Longitudinal measures of visual function, tumor volume, and prediction of visual outcomes after treatment of optic pathway gliomas. Ophthalmology 119 (6): 1231-7, 2012.22364864
Liu APY, Hastings C, Wu S, et al.: Treatment burden and long-term health deficits of patients with low-grade gliomas or glioneuronal tumors diagnosed during the first year of life. Cancer 125 (7): 1163-1175, 2019.30620400
de Blank PM, Fisher MJ, Lu L, et al.: Impact of vision loss among survivors of childhood central nervous system astroglial tumors. Cancer 122 (5): 730-9, 2016.26755438
Whelan KF, Stratton K, Kawashima T, et al.: Ocular late effects in childhood and adolescent cancer survivors: a report from the childhood cancer survivor study. Pediatr Blood Cancer 54 (1): 103-9, 2010.19774634
Chodick G, Sigurdson AJ, Kleinerman RA, et al.: The Risk of Cataract among Survivors of Childhood and Adolescent Cancer: A Report from the Childhood Cancer Survivor Study. Radiat Res 185 (4): 366-74, 2016.27023263
Alloin AL, Barlogis V, Auquier P, et al.: Prevalence and risk factors of cataract after chemotherapy with or without central nervous system irradiation for childhood acute lymphoblastic leukaemia: an LEA study. Br J Haematol 164 (1): 94-100, 2014.24116693
Bates JE, Indelicato DJ, Morris CG, et al.: Visual decline in pediatric survivors of brain tumors following radiotherapy. Acta Oncol 59 (10): 1257-1262, 2020.32762400
Hoehn ME, Vestal R, Calderwood J, et al.: Ocular Complications in School-Age Children and Adolescents after Allogeneic Bone Marrow Transplantation. Am J Ophthalmol 213: 153-160, 2020.32006482
Ferry C, Gemayel G, Rocha V, et al.: Long-term outcomes after allogeneic stem cell transplantation for children with hematological malignancies. Bone Marrow Transplant 40 (3): 219-24, 2007.17530002
Fahnehjelm KT, Törnquist AL, Olsson M, et al.: Visual outcome and cataract development after allogeneic stem-cell transplantation in children. Acta Ophthalmol Scand 85 (7): 724-33, 2007.17725615
Gurney JG, Ness KK, Rosenthal J, et al.: Visual, auditory, sensory, and motor impairments in long-term survivors of hematopoietic stem cell transplantation performed in childhood: results from the Bone Marrow Transplant Survivor study. Cancer 106 (6): 1402-8, 2006.16453335
Kal HB, VAN Kempen-Harteveld ML: Induction of severe cataract and late renal dysfunction following total body irradiation: dose-effect relationships. Anticancer Res 29 (8): 3305-9, 2009.19661349
Holmström G, Borgström B, Calissendorff B: Cataract in children after bone marrow transplantation: relation to conditioning regimen. Acta Ophthalmol Scand 80 (2): 211-5, 2002.11952491 21949511
Horwitz M, Auquier P, Barlogis V, et al.: Incidence and risk factors for cataract after haematopoietic stem cell transplantation for childhood leukaemia: an LEA study. Br J Haematol 168 (4): 518-25, 2015.25284463
Jeppesen H, Kielsen K, Siersma V, et al.: Ocular graft-versus-host disease and dry eye disease after paediatric haematopoietic stem cell transplantation - incidence and risk factors. Bone Marrow Transplant 57 (3): 487-498, 2022.35042981

## Late Effects of the Urinary System

Acute toxicity of the urinary system from cancer therapy is well known. Less is known about the genitourinary outcomes in long-term survivors.[1] The evidence for long-term renal injury in childhood cancer survivors is limited by studies characterized by small sample size, cohort selection and participation bias, cross-sectional assessment, heterogeneity in time since treatment, and method of ascertainment. In particular, the inaccuracies of diagnosing chronic kidney dysfunction by estimating equations of glomerular dysfunction should be considered.[2]

The incidence of late major surgical interventions among childhood cancer survivors was examined through data from the Childhood Cancer Survivor Study (CCSS). Childhood cancer survivors were more likely to undergo a major renal or urinary surgical late intervention than siblings (adjusted relative risk [RR], 2.0). Locoregional surgery or radiation therapy cancer treatments were associated with undergoing late surgical intervention in the same body region or organ system.[3]

Cancer treatments predisposing to renal injury and/or high blood pressure later in life include the following:

- Chemotherapeutic drugs (cisplatin, carboplatin, ifosfamide, methotrexate).
- Renal radiation therapy.
- Nephrectomy.

The risk and degree of renal dysfunction depend on type and intensity of therapy, and the interpretation of the studies is compromised by variability in testing.

The incidence of and risk factors for late-onset kidney failure among long-term survivors of childhood cancer has not been well studied.

Among 25,530 CCSS participants (median follow-up, 22.3 years), the 35-year cumulative incidence of self-reported late-onset kidney failure—defined as dialysis, renal transplant, or death attributable to kidney disease—was 1.7% (compared with 0.2% in the sibling cohort).[4]

- Independent treatment risk factors for late-onset kidney failure included high-dose (>15 Gy) radiation exposing the kidney (RR, 4.0), high-dose (>250 mg/m^2^) anthracycline (RR, 1.6), any ifosfamide dose (RR, 2.6), and nephrectomy (RR, 1.9).
- Modifiable risk factors associated with late-onset kidney failure included hypertension (RR, 14.4 with history of nephrectomy; RR, 5.9 without history of nephrectomy) and diabetes (RR, 2.2).

Few large-scale studies have evaluated late renal-health outcomes and risk factors for renal dysfunction among survivors treated with potentially nephrotoxic modalities.

Evidence (renal dysfunction in childhood cancer survivors):

1. The Dutch Childhood Cancer Survivor Study (DCCSS)-LATER 2 kidney analysis, a nationwide cross-sectional cohort study, evaluated 1,024 cancer survivors (aged 18 years or older at the time of the study). These patients were 5 or more years from diagnosis and treated between 1963 and 2001 with nephrectomy, abdominal radiation therapy, total-body irradiation (TBI), cisplatin, carboplatin, ifosfamide, high-dose cyclophosphamide, or hematopoietic stem cell transplant (HSCT). These survivors were compared with 500 age- and sex-matched controls.[5]
  - In 3.7% of the survivors (median age, 32 years), the glomerular filtration rate (GFR) was under 60 mL/min/1.73m^2^, compared with none of the controls showing a GFR decrease.
  - End-stage kidney disease was present in 1.1% of survivors.
  - Chronic kidney disease, according to age-thresholds (GFR under 75 for people aged <40 years, GFR under 60 for people aged 40–65 years, and GFR under 40 for people aged >65 years), was 6.6% in survivors, compared with 0.2% in controls.
  - Risk factors for chronic kidney disease, based on multivariable analyses, included treatment with nephrectomy (odds ratio [OR], 3.7), abdominal radiation therapy (OR, 1.8), ifosfamide (especially >12 gm/m^2^; OR, 2.9) and cisplatin doses higher than 500 mg/m^2^ (OR, 7.2).
  - Albuminuria (albumin-to-creatinine-ratio over 3 mg/mmol) was identified in 16.2% of survivors and 1.2% of controls. Risk factors for albuminuria included treatment with TBI (OR, 2.3), abdominal radiation therapy higher than 30 Gy (OR, 2.6), and ifosfamide (OR, 1.6).
  - After a median follow-up of 25.5 years, the overall prevalence of electrolyte losses in childhood cancer survivors (magnesium 5.6%, potassium 4.5%, phosphate 5.5%) was not higher than that in controls.[6]
  - Risk factors for hypertension were abdominal radiation therapy and TBI. Hypertension is associated with decreased GFR in childhood cancer survivors.[6]
2. French CCSS investigators linked national health care system data with clinical and treatment data from medical records to evaluate long-term risk of renal- or urinary-related hospitalization in survivors of childhood cancer.[7]
  - Among 5,498 survivors (median age at diagnosis, 5 years; median time from diagnosis, 22.9 years), 230 were hospitalized for renal or urinary tract indications.
  - The most common indication for renal hospitalization was dialysis (64.5%), whereas indications for urinary-related hospitalization included urolithiasis (73.2%), followed by diseases of the bladder (15.7%).
  - The risk of renal hospitalization was almost threefold (standardized hospitalization ratio, 2.9; 95% confidence interval [CI], 2.4–3.4) compared with the general population.
  - Exposing more than 10% of the kidney volume to at least 20 Gy of radiation was associated with a twofold (standardized hospitalization ratio, 2.2; 95% CI, 1.3–3.6) increased risk of hospitalization for renal causes.
  - Survivors treated with nephrectomy and high doses of ifosfamide (>60 g/m^2^) had more than a 20-fold risk of hospitalization for renal causes (RR, 23.7; 95% CI, 5.1–110.0).

Chronic comorbidities were assessed in a cohort of 6,778 2-year survivors of adolescent and young adult (AYA) cancer (defined as diagnosed with cancer between ages 15–39 years), with a median follow-up of 5.1 years after cancer diagnosis. Survivors of AYA cancer had a twofold to threefold increased risk of renal failure. The risk of developing chronic comorbidities was compared with matched individuals without a history of cancer.[8]

### Therapy-Related Factors Affecting the Kidney

Cancer treatments predisposing to late renal injury and hypertension include the following:[9,10]

#### Nephrectomy

- Survivors of childhood cancer who have undergone nephrectomy are at risk of hyperfiltration injury.
- Compensatory hypertrophy of the remaining kidney typically occurs after nephrectomy, but over time, renal injury may manifest as reduced glomerular filtration, microalbuminuria and proteinuria, hypertension, and, rarely, focal glomerulosclerosis leading to chronic renal failure.[9,11]
- Patients with nonsyndromic unilateral Wilms tumor treated with unilateral radical nephrectomy have a 35-year cumulative incidence of late kidney failure of 2.4%, an approximately 10-fold increased rate relative to siblings. No single chemotherapy–related or radiation therapy–related exposure was associated with late kidney failure in a CCSS study of late health outcomes in Wilms tumor survivors (n = 2,008).[12]
- A meta-analysis examined data from 23 studies of patients with Wilms tumor (293 unilateral cases and 386 bilateral cases). The study demonstrated significantly increased odds of developing abnormal kidney function (OR, 4.29; 95% CI, 1.02–18.00) and having a lower estimated GFR (mean, -8.99) among patients treated with radical nephrectomy, compared with those treated with nephron-sparing surgery. Patients with bilateral Wilms tumor (mean follow-up, 7.7 years) treated with radical nephrectomy and contralateral nephron-sparing surgery had higher odds of developing abnormal kidney function (OR, 3.82; 95% CI, 1.76–8.33) and hypertension (OR, 5.81; 95% CI, 1.31–25.86), compared with those treated with bilateral nephron-sparing surgery.[13]

#### Chemotherapy

Cisplatin, carboplatin, and ifosfamide are all risk factors for the development of kidney tubular dysfunction.[5]

##### Cisplatin

Cisplatin can cause glomerular and tubular damage, resulting in a diminished GFR and electrolyte wasting (particularly magnesium, calcium, and potassium).

- Acute cisplatin-related nephrotoxicity has been reported in 30% to 100% of exposed children.[14] However, the prevalence of persistent renal dysfunction in long-term survivors appears to be considerably lower.
- The DCCSS-LATER 2 kidney analysis, a nationwide cross-sectional cohort study, evaluated 1,024 survivors (aged 18 years or older at the time of the study) for long-term tubular dysfunction. These patients were 5 or more years from diagnosis and treated between 1963 and 2001 with nephrectomy, abdominal radiation therapy, TBI, cisplatin, carboplatin, ifosfamide, high-dose cyclophosphamide, or HSCT. Survivors were compared with 500 age- and sex-matched controls.[6]
  - In general, prevalence and ORs for magnesium loss were significantly increased for childhood cancer survivors treated with cisplatin only (25.8%) or in combination with carboplatin (23.1%).
  - Magnesium loss was associated with all doses of cisplatin but highest for a cumulative dose greater than 500 mg/m^2^ (OR, 22.0). Childhood cancer survivors exposed only to cisplatin were at risk for potassium loss in comparison with controls (prevalence, 12%; OR, 3.2).
  - At cumulative doses of cisplatin of higher than 500 mg/m^2^, the odds for potassium (OR, 17.7) and phosphate loss (OR, 3.6) were increased.
- Among 63 children treated with platinum agents, GFR was less than 60 mL/min per 1.73 m^2^ in 11% of children, and hypomagnesemia requiring oral supplements occurred in 7% of children at 10 years from completion of therapy.[15]

##### Carboplatin

Carboplatin is a cisplatin analogue and is less nephrotoxic than cisplatin.

- In a prospective, longitudinal, single-center, cohort study of children monitored for more than 10 years after cisplatin or carboplatin therapy, older age at treatment was found to be the major risk factor for nephrotoxicity, especially for patients who received carboplatin, while cisplatin dose schedule and cumulative carboplatin dose were also important predictors of toxicity. Platinum nephrotoxicity did not change significantly over 10 years.[15]
- The DCCSS-LATER 2 kidney analysis, a nationwide cross-sectional cohort study, evaluated 1,024 survivors (aged 18 years or older at the time of the study) for long-term tubular dysfunction. In multivariable risk analysis, after a median follow-up of 25.5 years, carboplatin was associated with potassium loss at a cumulative dose higher than 2,800 mg/m^2^ (OR, 5.1).[6]
- The combination of carboplatin and ifosfamide may be associated with more renal damage than the combination of cisplatin and ifosfamide.[15-17]

##### Ifosfamide

Ifosfamide can also cause glomerular and tubular toxicity, with renal tubular acidosis and Fanconi syndrome, a proximal tubular defect characterized by impairment of resorption of glucose, amino acids, phosphate, and bicarbonate.

- The DCCSS-LATER 2 kidney analysis, a nationwide cross-sectional cohort study, evaluated 1,024 survivors (aged 18 years or older at the time of the study) who had received potentially nephrotoxic therapy for long-term tubular dysfunction. In multivariable risk analysis, after a median follow-up of 25.5 years, ifosfamide was associated with potassium loss (OR, 2.4) and phosphate loss (OR, 2.3) (with cumulative dose >42 g/m^2^).[6]
- Ifosfamide doses greater than 60 g/m^2^, age younger than 5 years at treatment, and combination with cisplatin and carboplatin increase the risk of ifosfamide-associated renal tubular toxicity.[18-20]

##### Methotrexate

High-dose methotrexate (1,000–33,000 mg/m^2^) has been reported to cause acute renal dysfunction in up to 12.4% of patients. Long-term renal sequelae have not been described.[21]

#### Radiation therapy

Radiation therapy to the kidney can result in radiation nephritis or nephropathy after a latent period of 3 to 12 months.

- The kidney is relatively radiosensitive, with a tolerance dose of 20 Gy.[22]
- Doses of 18 Gy are considered unlikely to cause severe or chronic renal sequelae. In contrast, up to 50% of individuals treated with 20 Gy may develop glomerular dysfunction or hypertension within 20 years.[23]
- Specific quantitative data are sparse, but a study of 108 children treated for Wilms tumor who had undergone unilateral nephrectomy showed that 41% of children who received less than 12 Gy of radiation to the contralateral remaining kidney, 56% of children who received 12 Gy to 24 Gy, and 91% of children who received more than 24 Gy had a decreased creatinine clearance (GFR <63 mL/min/m^2^).[24]
- In a report from the German Registry for the Evaluation of Side Effects after Radiation in Childhood and Adolescence (RISK consortium), 126 patients who underwent radiation therapy to parts of the kidneys for various cancers were evaluated. All patients had also received potentially nephrotoxic chemotherapy. Whole-kidney volumes exposed to greater than 20 Gy (P = .031) or 30 Gy (P = .003) of radiation were associated with a greater risk of nephrotoxicity.[25]
- Risk factors for radiation injury include the following:
  - Age at time of radiation therapy.
    - Neonates appear to have an increased sensitivity to radiation therapy; doses of 12 Gy to 24 Gy at 1.25 Gy to 1.5 Gy per fraction to the entire kidney were associated with a decreased GFR.[26]
    - However, for older children, there is no convincing evidence that age at the time of radiation therapy is related to renal injury.[26]
  - Unilateral versus bilateral radiation therapy.
    - In the National Wilms Tumor Study experience, renal failure was more common in children with bilateral tumors than in children with unilateral tumors.[27]
    - The effects of radiation also depend on whether partial or whole-kidney radiation therapy is administered. Renal failure is rare after the administration of partial-volume radiation doses between 12 Gy and 27 Gy.[28]
    - When certain agents such as cyclosporine and teniposide are not used, TBI doses of up to 13 Gy are associated with a less than 8% incidence of kidney toxicity.[29]
  - HSCT.
    - Chronic kidney disease is a long-term complication of HSCT that has been variably associated with acute kidney injury, lower pretransplant renal function, TBI, conditioning regimens such as fludarabine, graft-versus-host disease, and use of calcineurin inhibitors.[30-32]
    - Most reports of renal outcomes among long-term survivors of childhood cancer treated with HSCT are limited to descriptive outcomes of very small cohorts.
    - For more information, see the Urinary System Late Effects section in Complications, Graft-Versus-Host Disease, and Late Effects After Pediatric Hematopoietic Stem Cell Transplant.

A comprehensive Pediatric Normal Tissue Effects in the Clinic (PENTEC) review by the genitourinary task force evaluated dosimetric and clinical factors to radiation dose-volume relationships for genitourinary dysfunction, including kidney, bladder, and hypertension, for pediatric malignancies. The effect of chemotherapy was also considered.[33]

- The risk of toxicity from 10.5 Gy whole-abdomen irradiation was low among patients with Wilms tumor (risks of ≥grade 2 toxicity, 4% and risks of ≥grade 3 toxicity, 1%).
- For fractionated 12-Gy TBI with various combinations of chemotherapy, the risk of severe toxicity was low, but low-grade toxicity was more common (risks of ≥grade 2 toxicity, 8% and risks of ≥grade 3 toxicity, 3%).
- With a cisplatin dose of 480 mg/m^2^, a 3% risk of grade 3 or higher toxicity occurred without radiation, and a 5% risk when 26% of the kidney received 10 Gy or higher.
- With an ifosfamide dose of 63 g/m^2^, a 5% risk of grade 3 or higher toxicity occurred without radiation, and a 10% toxicity risk occurred when 42% of the kidney received 10 Gy or higher.

### Renal Function in Survivors of Nonsyndromic Wilms Tumor

- Researchers used the CCSS to evaluate the long-term mortality and chronic health conditions among unilateral, nonsyndromic Wilms tumor survivors (n = 2,008) diagnosed over 3 decades. The 35-year cumulative incidence of late kidney failure among survivors was 2.4% (approximately 10-fold increased rate relative to siblings). The 20-year rate for late kidney failure was 1.7%, and it increased with age. Survivors were at increased risk for kidney failure (RR, 11.9), compared with siblings.[12]
- St. Jude Life (SJLIFE) study investigators evaluated the impact of specific treatment modalities on long-term renal function and blood pressure among adult survivors of Wilms tumor.[34]
  - Among 40 survivors of unilateral nonsyndromic Wilms tumor, the prevalence of hypertension was significantly increased for unirradiated (25%) and irradiated (35%) survivors, compared with the prevalence in 35 noncancer controls (0%).
  - No irradiated or unirradiated participant had an estimated GFR (creatinine + cystatin C) less than 60 mL/min/1.73 m^2^.
- Adult survivors of unilateral, nonmetastatic, nonsyndromic Wilms tumor who were treated with whole-abdomen radiation therapy are at risk of impaired kidney function. In a pilot study from the SJLIFE cohort, the accuracy of equations evaluating kidney function was assessed in this group of patients.[35]
  - Kidney function may be decreased in female survivors (n = 48) who received whole-abdomen radiation therapy when compared with female survivors who did not receive whole-abdomen radiation therapy and controls.
  - Kidney function of males exposed to whole-abdomen radiation therapy (n = 27) appeared unimpaired.
  - The results of the estimating equations did not correlate with technetium Tc 99m-diethylenetriamine pentaacetic acid (99mTc-DTPA) plasma clearance in irradiated or unirradiated females.
  - The estimated GFR (creatinine) and estimated GFR (creatinine + cystatin C) correlated with 99mTc-DTPA plasma clearance in unirradiated and irradiated males.
  - This report suggests that female survivors who underwent unilateral nephrectomy and were screened with estimated GFR could be misclassified as having normal renal function. However, larger cohorts of Wilms tumor survivors need to be evaluated to validate these findings.

### Genetic Factors Predisposing to Renal Dysfunction

- Many childhood survivors of Wilms tumor who develop chronic renal failure have syndromes accompanying WT1 variants or deletions that predispose to renal disease.
- Data from the National Wilms Tumor Study Group and the U.S. Renal Data System indicate that the 20-year cumulative incidence of end-stage renal disease is 74% in children with unilateral Wilms tumor and Denys-Drash syndrome, 36% for those with WAGR (Wilms tumor, aniridia, genitourinary abnormalities, and range of developmental delays) syndrome, 7% for male patients with genitourinary anomalies, and 0.6% for patients with none of these conditions.[36]
- For patients with bilateral Wilms tumors, the incidence of end-stage renal disease is 50% for Denys-Drash syndrome, 90% for WAGR syndrome, 25% for genitourinary anomaly, and 12% for others.[36,37]
- End-stage renal disease in patients with WAGR syndrome and genitourinary anomalies tended to occur relatively late, and often during or after adolescence.[36]

### Predicting Risk of Kidney Failure

CCSS investigators developed prediction models for kidney failure using demographic and treatment characteristics of 5-year survivors of childhood cancer. The models were validated using follow-up data from survivors in the SJLIFE study and National Wilms Tumor Study.[38]

- In the CCSS, survivor-reported history of subsequent kidney failure (i.e., dialysis, kidney transplant, or kidney-related death) by age 40 years was confirmed by linkage with the Organ Procurement and Transplantation Network and the National Death Index.
- Models integrated clinical data such as race and ethnicity, age at diagnosis, nephrectomy, chemotherapy, radiation therapy, congenital genitourinary anomalies, and early-onset hypertension to estimate the relationships between potential predictors and kidney failure and magnitude of risk.
- The risk prediction models accurately identify survivors at low, moderate, and high risk of late kidney failure who may benefit from screening and intervention.
- The online calculator can be found on the CCSS website (https://ccss.stjude.org/resources/calculators/kidney-failure-calculator.html).

### Therapy-Related Bladder Complications

Pelvic or central nervous system surgery, alkylator-containing chemotherapy such as cyclophosphamide or ifosfamide, pelvic radiation therapy, and certain spinal and genitourinary surgical procedures have been associated with urinary bladder late effects, as follows:

#### Chemotherapy

- The oxazaphosphorine alkylating agents (cyclophosphamide and ifosfamide) and radiation therapy exposing the bladder have been implicated in the development of hemorrhagic cystitis.
- Chemotherapy-associated hemorrhagic cystitis presents as an acute toxicity and appears to be a rare persistent effect among clinically well characterized long-term survivor cohorts.[39,40]
- In a study of 6,119 children treated between 1986 and 2010 (mean age, 12.2 years ± 6.3 standard deviation), 1.6% of patients (n = 97) developed hemorrhagic cystitis (manifesting at mean 2.7 months after transplant induction therapy and mean 12.4 months after pelvic radiation), most of whom (75%) had severity scores of II or III (scale, I–IV).[41]
  - Patients with radiological evidence of renal or bladder calculi or tumors that invaded the bladder wall were excluded from the study.
  - Older age, previous bone marrow or peripheral blood HSCT, and BK virus in the urine were risk factors for hemorrhagic cystitis and were associated with a higher severity score.
- Previous exposure to cyclophosphamide has been linked to risk of bladder carcinoma. An excess prevalence of bladder tumors has also been observed in survivors of specific diagnostic types (e.g., heritable retinoblastoma), supporting the contribution of genetic factors in the development of subsequent neoplasms.[42,43]

#### Radiation therapy

- Pelvic radiation therapy is also associated with an increased risk of hemorrhagic cystitis that may be either acute or chronic in presentation.
- The risk of radiation-induced hemorrhagic cystitis is greatest among survivors treated with radiation doses of more than 30 Gy to the whole bladder or more than 60 Gy to a portion of the bladder.[44]
- Long-term bladder fibrosis and contracture may result as sequelae from hemorrhagic cystitis or radiation therapy.[44]

#### Surgery

- Surgical procedures involving the lower genitourinary tract have the potential to impair normal function of the bladder and normal voiding mechanisms.
- Any cancer therapy or tumor infiltration that disrupts innervation of the bladder can have deleterious effects on bladder function that may manifest as impaired bladder storage, inability to void, and/or incontinence.
- Children who have undergone ileal enterocystoplasty for bladder augmentation are at risk of developing a vitamin B_12_ deficiency. Serum B_12_ levels decrease over time after the procedure, with the greatest risk occurring 7 years postoperatively.[45]

### Kidney Transplant

In a study of solid organ transplants in 13,318 survivors in the CCSS, 71 survivors had end-stage kidney disease that warranted kidney transplants, 50 of whom received a kidney transplant.[46]

- At 35 years after cancer diagnosis, the cumulative incidence of a kidney transplant was 0.39%, and the cumulative incidence of being placed on the waiting list or receiving a kidney was 0.54%.
- Exposure to ifosfamide and receiving TBI were associated with the highest hazard ratio for being placed on the waiting list or receiving a kidney transplant.
- The 5-year survival rate from the time of kidney transplant was 93.5%, which is similar to that of the general population in the same age range.

Table 21 summarizes kidney and bladder late effects and the related health screenings.

Table 21. Kidney and Bladder Late Effects^a^

Predisposing Therapy | Renal/Genitourinary Effects | Health Screening
Cisplatin/carboplatin; ifosfamide; calcineurin inhibitors | Renal toxicity (glomerular injury, tubular injury [renal tubular acidosis], Fanconi syndrome, hypophosphatemic rickets) | Blood pressure
Cisplatin/carboplatin; ifosfamide; calcineurin inhibitors | Renal toxicity (glomerular injury, tubular injury [renal tubular acidosis], Fanconi syndrome, hypophosphatemic rickets) | BUN, Creatinine, Na, K, Cl, CO_2_, Ca, Mg, PO_4_ levels
Cisplatin/carboplatin; ifosfamide; calcineurin inhibitors | Renal toxicity (glomerular injury, tubular injury [renal tubular acidosis], Fanconi syndrome, hypophosphatemic rickets) | Urinalysis
Cisplatin/carboplatin; ifosfamide; calcineurin inhibitors | Renal toxicity (glomerular injury, tubular injury [renal tubular acidosis], Fanconi syndrome, hypophosphatemic rickets) | Electrolyte supplements for patients with persistent electrolyte wasting
Cisplatin/carboplatin; ifosfamide; calcineurin inhibitors | Renal toxicity (glomerular injury, tubular injury [renal tubular acidosis], Fanconi syndrome, hypophosphatemic rickets) | Nephrology consultation for patients with hypertension, proteinuria, or progressive renal insufficiency
Methotrexate; radiation exposing kidneys/urinary tract | Renal toxicity (renal insufficiency, hypertension) | Blood pressure
Methotrexate; radiation exposing kidneys/urinary tract | Renal toxicity (renal insufficiency, hypertension) | BUN, Creatinine, Na, K, Cl, CO_2_, Ca, Mg, PO_4_ levels
Methotrexate; radiation exposing kidneys/urinary tract | Renal toxicity (renal insufficiency, hypertension) | Urinalysis
Methotrexate; radiation exposing kidneys/urinary tract | Renal toxicity (renal insufficiency, hypertension) | Nephrology consultation for patients with hypertension, proteinuria, or progressive renal insufficiency
Nephrectomy | Renal toxicity (proteinuria, hyperfiltration, renal insufficiency) | Blood pressure
Nephrectomy | Renal toxicity (proteinuria, hyperfiltration, renal insufficiency) | BUN, Creatinine, Na, K, Cl, CO_2_, Ca, Mg, PO_4_ levels
Nephrectomy | Renal toxicity (proteinuria, hyperfiltration, renal insufficiency) | Urinalysis
Nephrectomy | Renal toxicity (proteinuria, hyperfiltration, renal insufficiency) | Discuss contact sports, bicycle safety (e.g., avoiding handlebar injuries), and proper use of seatbelts (i.e., wearing lap belts around hips, not waist)
Nephrectomy | Renal toxicity (proteinuria, hyperfiltration, renal insufficiency) | Counsel to use NSAIDs with caution
Nephrectomy | Renal toxicity (proteinuria, hyperfiltration, renal insufficiency) | Nephrology consultation for patients with hypertension, proteinuria, or progressive renal insufficiency
Nephrectomy; pelvic surgery; cystectomy | Hydrocele | Testicular examination
Cystectomy | Cystectomy-related complications (chronic urinary tract infections, renal dysfunction, vesicoureteral reflux, hydronephrosis, reservoir calculi, spontaneous neobladder perforation, vitamin B_12_/folate/carotene deficiency [patients with ileal enterocystoplasty only]) | Urology evaluation
Cystectomy | | Vitamin B_12_ level
Pelvic surgery; cystectomy | Urinary incontinence; urinary tract obstruction | History: hematuria, urinary urgency/frequency, urinary incontinence/retention, dysuria, nocturia, abnormal urinary stream
Pelvic surgery; cystectomy | Urinary incontinence; urinary tract obstruction | Counsel regarding adequate fluid intake, regular voiding, seeking medical attention for symptoms of voiding dysfunction or urinary tract infection, compliance with recommended bladder catheterization regimen
Pelvic surgery; cystectomy | Urinary incontinence; urinary tract obstruction | Urologic consultation for patients with dysfunctional voiding or recurrent urinary tract infections
Cyclophosphamide/Ifosfamide; radiation exposing bladder/urinary tract | Bladder toxicity (hemorrhagic cystitis, bladder fibrosis, dysfunctional voiding, vesicoureteral reflux, hydronephrosis) | History: hematuria, urinary urgency/frequency, urinary incontinence/retention, dysuria, nocturia, abnormal urinary stream
Cyclophosphamide/Ifosfamide; radiation exposing bladder/urinary tract | Bladder toxicity (hemorrhagic cystitis, bladder fibrosis, dysfunctional voiding, vesicoureteral reflux, hydronephrosis) | Urinalysis
Cyclophosphamide/Ifosfamide; radiation exposing bladder/urinary tract | Bladder toxicity (hemorrhagic cystitis, bladder fibrosis, dysfunctional voiding, vesicoureteral reflux, hydronephrosis) | Urine culture, spot urine calcium/creatinine ratio, and ultrasound of kidneys and bladder for patients with microscopic hematuria (defined as ≥5 RBC/HFP on at least 2 occasions)
Cyclophosphamide/Ifosfamide; radiation exposing bladder/urinary tract | Bladder toxicity (hemorrhagic cystitis, bladder fibrosis, dysfunctional voiding, vesicoureteral reflux, hydronephrosis) | Nephrology or urology referral for patients with culture-negative microscopic hematuria AND abnormal ultrasound and/or abnormal calcium/creatinine ratio
Cyclophosphamide/Ifosfamide; radiation exposing bladder/urinary tract | Bladder toxicity (hemorrhagic cystitis, bladder fibrosis, dysfunctional voiding, vesicoureteral reflux, hydronephrosis) | Urology referral for patients with culture negative macroscopic hematuria

BUN = blood urea nitrogen; NSAIDs = nonsteroidal anti-inflammatory drugs; RBC/HFP = red blood cells per high-field power (microscopic examination).

^a^Adapted from the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

For urinary late effects information, including risk factors, evaluation, and health counseling, see the Children's Oncology Group Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/).

### References

Shnorhavorian M, Friedman DL, Koyle MA: Genitourinary long-term outcomes for childhood cancer survivors. Curr Urol Rep 10 (2): 134-7, 2009.19239818
Green DM: Evaluation of renal function after successful treatment for unilateral, non-syndromic Wilms tumor. Pediatr Blood Cancer 60 (12): 1929-35, 2013.24039069
Dieffenbach BV, Murphy AJ, Liu Q, et al.: Cumulative burden of late, major surgical intervention in survivors of childhood cancer: a report from the Childhood Cancer Survivor Study (CCSS) cohort. Lancet Oncol 24 (6): 691-700, 2023.37182536
Dieffenbach BV, Liu Q, Murphy AJ, et al.: Late-onset kidney failure in survivors of childhood cancer: a report from the Childhood Cancer Survivor Study. Eur J Cancer 155: 216-226, 2021.34391054
Kooijmans ECM, van der Pal HJH, Pluijm SMF, et al.: The Dutch Childhood Cancer Survivor Study (DCCSS)-LATER 2 kidney analysis examined long-term glomerular dysfunction in childhood cancer survivors. Kidney Int 102 (5): 1136-1146, 2022.35772499
Kooijmans ECM, van der Pal HJH, Pluijm SMF, et al.: Long-Term Tubular Dysfunction in Childhood Cancer Survivors; DCCSS-LATER 2 Renal Study. Cancers (Basel) 14 (11): , 2022.35681735
Mansouri I, Schwartz B, Vu-Bezin G, et al.: Risk of Renal or Urinary Related Hospitalization in Survivors of Childhood Cancer: Results from the French Childhood Cancer Survivor Study. Cancer Epidemiol Biomarkers Prev 32 (4): 572-581, 2023.36692978
Chao C, Bhatia S, Xu L, et al.: Chronic Comorbidities Among Survivors of Adolescent and Young Adult Cancer. J Clin Oncol 38 (27): 3161-3174, 2020.32673152
Dekkers IA, Blijdorp K, Cransberg K, et al.: Long-term nephrotoxicity in adult survivors of childhood cancer. Clin J Am Soc Nephrol 8 (6): 922-9, 2013.23411430
Mulder RL, Knijnenburg SL, Geskus RB, et al.: Glomerular function time trends in long-term survivors of childhood cancer: a longitudinal study. Cancer Epidemiol Biomarkers Prev 22 (10): 1736-46, 2013.24064520
Knijnenburg SL, Jaspers MW, van der Pal HJ, et al.: Renal dysfunction and elevated blood pressure in long-term childhood cancer survivors. Clin J Am Soc Nephrol 7 (9): 1416-27, 2012.22822016
Weil BR, Murphy AJ, Liu Q, et al.: Late Health Outcomes Among Survivors of Wilms Tumor Diagnosed Over Three Decades: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 41 (14): 2638-2650, 2023.36693221
Khondker A, Jain A, Groff ML, et al.: Late Kidney Effects of Nephron-Sparing vs Radical Nephrectomy for Wilms Tumor: A Systematic Review and Meta-Analysis. J Urol 207 (3): 513-523, 2022.34963311
Skinner R, Kaplan R, Nathan PC: Renal and pulmonary late effects of cancer therapy. Semin Oncol 40 (6): 757-73, 2013.24331195
Skinner R, Parry A, Price L, et al.: Persistent nephrotoxicity during 10-year follow-up after cisplatin or carboplatin treatment in childhood: relevance of age and dose as risk factors. Eur J Cancer 45 (18): 3213-9, 2009.19850470
Marina NM, Poquette CA, Cain AM, et al.: Comparative renal tubular toxicity of chemotherapy regimens including ifosfamide in patients with newly diagnosed sarcomas. J Pediatr Hematol Oncol 22 (2): 112-8, 2000 Mar-Apr.10779023
Hartmann JT, Fels LM, Franzke A, et al.: Comparative study of the acute nephrotoxicity from standard dose cisplatin +/- ifosfamide and high-dose chemotherapy with carboplatin and ifosfamide. Anticancer Res 20 (5C): 3767-73, 2000 Sep-Oct.11268452
Skinner R, Cotterill SJ, Stevens MC: Risk factors for nephrotoxicity after ifosfamide treatment in children: a UKCCSG Late Effects Group study. United Kingdom Children's Cancer Study Group. Br J Cancer 82 (10): 1636-45, 2000.10817497
Stöhr W, Paulides M, Bielack S, et al.: Ifosfamide-induced nephrotoxicity in 593 sarcoma patients: a report from the Late Effects Surveillance System. Pediatr Blood Cancer 48 (4): 447-52, 2007.16628552
Oberlin O, Fawaz O, Rey A, et al.: Long-term evaluation of Ifosfamide-related nephrotoxicity in children. J Clin Oncol 27 (32): 5350-5, 2009.19826134
Daetwyler E, Bargetzi M, Otth M, et al.: Late effects of high-dose methotrexate treatment in childhood cancer survivors-a systematic review. BMC Cancer 22 (1): 267, 2022.35287628
Cohen EP, Robbins ME: Radiation nephropathy. Semin Nephrol 23 (5): 486-99, 2003.13680538
Dawson LA, Kavanagh BD, Paulino AC, et al.: Radiation-associated kidney injury. Int J Radiat Oncol Biol Phys 76 (3 Suppl): S108-15, 2010.20171504
Mitus A, Tefft M, Fellers FX: Long-term follow-up of renal functions of 108 children who underwent nephrectomy for malignant disease. Pediatrics 44 (6): 912-21, 1969.4312366
Bölling T, Ernst I, Pape H, et al.: Dose-volume analysis of radiation nephropathy in children: preliminary report of the risk consortium. Int J Radiat Oncol Biol Phys 80 (3): 840-4, 2011.20638187
Peschel RE, Chen M, Seashore J: The treatment of massive hepatomegaly in stage IV-S neuroblastoma. Int J Radiat Oncol Biol Phys 7 (4): 549-53, 1981.7251423
Ritchey ML, Green DM, Thomas PR, et al.: Renal failure in Wilms' tumor patients: a report from the National Wilms' Tumor Study Group. Med Pediatr Oncol 26 (2): 75-80, 1996.8531856 96121141
Paulino AC, Wilimas J, Marina N, et al.: Local control in synchronous bilateral Wilms tumor. Int J Radiat Oncol Biol Phys 36 (3): 541-8, 1996.8948337
Cheng JC, Schultheiss TE, Wong JY: Impact of drug therapy, radiation dose, and dose rate on renal toxicity following bone marrow transplantation. Int J Radiat Oncol Biol Phys 71 (5): 1436-43, 2008.18355974
Hoffmeister PA, Hingorani SR, Storer BE, et al.: Hypertension in long-term survivors of pediatric hematopoietic cell transplantation. Biol Blood Marrow Transplant 16 (4): 515-24, 2010.19961945
Abboud I, Porcher R, Robin M, et al.: Chronic kidney dysfunction in patients alive without relapse 2 years after allogeneic hematopoietic stem cell transplantation. Biol Blood Marrow Transplant 15 (10): 1251-7, 2009.19747632
Ellis MJ, Parikh CR, Inrig JK, et al.: Chronic kidney disease after hematopoietic cell transplantation: a systematic review. Am J Transplant 8 (11): 2378-90, 2008.18925905
Poppe MM, Tai A, Li XA, et al.: Kidney Disease in Childhood Cancer Survivors Treated With Radiation Therapy: A PENTEC Comprehensive Review. Int J Radiat Oncol Biol Phys 119 (2): 560-574, 2024.37452796
Green DM, Wang M, Krasin MJ, et al.: Long-term renal function after treatment for unilateral, nonsyndromic Wilms tumor. A report from the St. Jude Lifetime Cohort Study. Pediatr Blood Cancer 67 (10): e28271, 2020.32706494
Green DM, Wang M, Krasin MJ, et al.: The accuracy of estimating equations for the evaluation of kidney function in adult survivors of unilateral, nonmetastatic, non-syndromic Wilms tumor: A pilot study from the St. Jude Lifetime Cohort Study. Pediatr Blood Cancer 72 (1): e31409, 2025.39502013
Breslow NE, Collins AJ, Ritchey ML, et al.: End stage renal disease in patients with Wilms tumor: results from the National Wilms Tumor Study Group and the United States Renal Data System. J Urol 174 (5): 1972-5, 2005.16217371
Hamilton TE, Ritchey ML, Haase GM, et al.: The management of synchronous bilateral Wilms tumor: a report from the National Wilms Tumor Study Group. Ann Surg 253 (5): 1004-10, 2011.21394016
Wu NL, Chen Y, Dieffenbach BV, et al.: Development and Validation of a Prediction Model for Kidney Failure in Long-Term Survivors of Childhood Cancer. J Clin Oncol 41 (12): 2258-2268, 2023.36795981
Hudson MM, Ness KK, Gurney JG, et al.: Clinical ascertainment of health outcomes among adults treated for childhood cancer. JAMA 309 (22): 2371-81, 2013.23757085
Landier W, Armenian SH, Lee J, et al.: Yield of screening for long-term complications using the children's oncology group long-term follow-up guidelines. J Clin Oncol 30 (35): 4401-8, 2012.23091100
Riachy E, Krauel L, Rich BS, et al.: Risk factors and predictors of severity score and complications of pediatric hemorrhagic cystitis. J Urol 191 (1): 186-92, 2014.23954584
Kersun LS, Wimmer RS, Hoot AC, et al.: Secondary malignant neoplasms of the bladder after cyclophosphamide treatment for childhood acute lymphocytic leukemia. Pediatr Blood Cancer 42 (3): 289-91, 2004.14752871
Frobisher C, Gurung PM, Leiper A, et al.: Risk of bladder tumours after childhood cancer: the British Childhood Cancer Survivor Study. BJU Int 106 (7): 1060-9, 2010.20184574
Ritchey M, Ferrer F, Shearer P, et al.: Late effects on the urinary bladder in patients treated for cancer in childhood: a report from the Children's Oncology Group. Pediatr Blood Cancer 52 (4): 439-46, 2009.18985721
Rosenbaum DH, Cain MP, Kaefer M, et al.: Ileal enterocystoplasty and B12 deficiency in pediatric patients. J Urol 179 (4): 1544-7; discussion 1547-8, 2008.18295265
Dietz AC, Seidel K, Leisenring WM, et al.: Solid organ transplantation after treatment for childhood cancer: a retrospective cohort analysis from the Childhood Cancer Survivor Study. Lancet Oncol 20 (10): 1420-1431, 2019.31471158

## Latest Updates to This Summary (04/14/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

General Information About Late Effects of Treatment for Childhood Cancer

Added Rossetti et al. as reference 44.

Subsequent Neoplasms (SNs)

Added Ghosh et al. as reference 17.

Revised text to state that keratinocyte carcinomas (KCs) are one of the most common SNs among childhood cancer survivors and show a strong association with radiation therapy (cited Boull et al. as reference 83).

Revised text to state that an updated analysis of the Childhood Cancer Survivor Study (CCSS) confirmed an increased risk of KCs among participants with histories of radiation therapy. Compared with participants who did not receive radiation therapy, CCSS participants treated with radiation therapy had a 4.5-fold increased risk of KCs. Also added text to state that the risk of KCs increased with higher radiation therapy doses. Per 10 Gy of radiation therapy at the KC site, the relative risk (RR) was similar for head/neck and extremity sites. The RR was slightly higher for trunk sites. Allogeneic and autologous hematopoietic stem cell transplant (HSCT) were associated with an increased risk of KCs.

Revised text to state that risk factors for malignant melanoma include radiation therapy higher than 40 Gy, alkylating agents, and bleomycin (cited Rotz et al. as reference 85).

Added text about the results of a study that assessed the incidence, risk factors, and outcomes for patients with melanoma in the CCSS cohort.

Late Effects of the Endocrine System

Added text about the results of a Dutch Childhood Cancer Survivors Study LATER 2 study that assessed the prevalence and determinants of metabolic syndrome in a cohort of 2,338 adult survivors of childhood cancer, compared with 132,226 adults without histories of cancer from the Lifelines cohort (cited Bolier et al. as reference 102).

Late Effects of the Musculoskeletal System

Added text about the results of a study that assessed bone mineral density deficits and associated risks factors in 3,919 5-year survivors in the St. Jude Lifetime (SJLIFE) cohort (cited Goodenough et al. as reference 35).

Revised text to state that the most important treatment factor associated with the development of osteonecrosis is prolonged exposure to corticosteroids, which is typical in treatment regimens used for acute lymphoblastic leukemia (ALL), Hodgkin lymphoma, non-Hodgkin lymphoma, and HSCT (cited Giertz et al. as reference 56).

Late Effects of the Urinary System

Added text to state that adult survivors of unilateral, nonmetastatic, nonsyndromic Wilms tumor who were treated with whole-abdomen radiation therapy are at risk of impaired kidney function. Also added text about the results of a pilot study from the SJLIFE cohort that assessed the accuracy of equations evaluating kidney function in this group of patients (cited Green et al. as reference 35).

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the late effects of treatment for childhood cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Late Effects of Treatment for Childhood Cancer are:

- Sally J. Cohen-Cutler, MD, MS (Children's Hospital of Philadelphia)
- Louis S. Constine, MD (James P. Wilmot Cancer Center at University of Rochester Medical Center)
- Nita Louise Seibel, MD (National Cancer Institute)
- Emily S. Tonorezos, MD, MPH (National Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Late Effects of Treatment for Childhood Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/childhood-cancers/late-effects-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389273]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).